# Genetics of Colorectal Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of colorectal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Executive Summary

This executive summary reviews the topics covered in the PDQ summary on the genetics of colorectal cancer (CRC), with hyperlinks to detailed sections below that describe the evidence on each topic.

- Inheritance and Risk
  Factors suggestive of a genetic contribution to CRC include the following: (1) a strong family history of CRC and/or polyps; (2) multiple primary cancers in a patient with CRC; (3) the existence of other cancers within the kindred consistent with known syndromes causing an inherited risk of CRC, such as endometrial cancer; and (4) early age at diagnosis of CRC. Hereditary CRC is most commonly inherited in an autosomal dominant pattern, although two syndromes are inherited in an autosomal recessive pattern (MUTYH-associated polyposis and NTHL1).
  At least three validated computer models are available to estimate the probability that an individual affected with cancer carries a pathogenic variant in a mismatch repair (MMR) gene associated with Lynch syndrome, the most common inherited CRC syndrome. These include the MMRpro, MMRpredict, and PREMM5 (PREdiction Model for gene Mutations) prediction models. Individuals with a quantified risk of 2.5% or greater on PREMM5 or 5% or greater on MMRpro and MMRpredict are recommended for genetic evaluation referral and testing.
- Associated Genes and Syndromes
  Hereditary CRC has two well-described forms: (1) polyposis (including familial adenomatous polyposis [FAP] and attenuated FAP [AFAP], which are caused by pathogenic variants in the APC gene; and MUTYH-associated polyposis, which is caused by pathogenic variants in the MUTYH gene); and (2) Lynch syndrome (often referred to as hereditary nonpolyposis colorectal cancer), which is caused by germline pathogenic variants in DNA MMR genes (MLH1, MSH2, MSH6, and PMS2) and EPCAM. Other CRC syndromes and their associated genes include oligopolyposis (POLE, POLD1), NTHL1, juvenile polyposis syndrome (BMPR1A, SMAD4), Cowden syndrome (PTEN), and Peutz-Jeghers syndrome (STK11). Many of these syndromes are also associated with extracolonic cancers and other manifestations. Serrated polyposis syndrome, which is characterized by the appearance of hyperplastic polyps, appears to have a familial component, but the genetic basis remains unknown. The natural history of some of these syndromes is still being described. Many other families exhibit aggregation of CRC and/or adenomas, but with no apparent association with an identifiable hereditary syndrome, and they are known collectively as familial CRC. In addition, most individuals with CRC diagnosed before age 50 years and without a family history of cancer do not have a pathogenic variant associated with an inherited cancer syndrome.
  Genome-wide searches are showing promise in identifying common, low-penetrance susceptibility alleles for many complex diseases, including CRCs, but the clinical utility of these findings remains uncertain.
- Clinical Management
  It is becoming the standard of care at many centers that all individuals with newly diagnosed CRC are evaluated for Lynch syndrome through molecular diagnostic tumor testing assessing MMR deficiency. A universal screening approach to tumor testing is supported, in which all CRC cases are evaluated regardless of age at diagnosis or fulfillment of existing clinical criteria for Lynch syndrome. A more cost-effective approach has been reported whereby all patients aged 70 years or younger with CRC and older patients who meet the revised Bethesda guidelines are tested for Lynch syndrome. Tumor evaluation often begins with immunohistochemistry testing for the expression of the MMR proteins associated with Lynch syndrome or microsatellite instability (MSI) testing, BRAF testing, and MLH1 hypermethylation analyses.
  Colonoscopy for CRC screening and surveillance is commonly performed in individuals with hereditary CRC syndromes and has been associated with improved survival outcomes. For example, surveillance of Lynch syndrome patients with colonoscopy every 1 to 2 years, and in one study up to 3 years, has been shown to reduce CRC incidence and mortality. Extracolonic surveillance is also a mainstay for some hereditary CRC syndromes depending on the other cancers associated with the syndrome. For example, regular endoscopic surveillance of the duodenum in FAP patients has been shown to improve survival.
  Prophylactic surgery (colectomy) has also been shown to improve survival in patients with FAP. The timing and extent of risk-reducing surgery usually depends on the number of polyps, their size, histology, and symptomatology. For patients with Lynch syndrome and a diagnosis of CRC, extended resection is associated with fewer metachronous CRCs and additional surgical procedures for colorectal neoplasia than in patients who undergo segmental resection for CRC. The surgical decision must consider the age of the patient, comorbidities, clinical stage of the tumor, sphincter function, and the patient’s wishes.
  Chemopreventive agents have also been studied in the management of FAP and Lynch syndrome. In FAP patients, celecoxib and sulindac have been associated with a decrease in polyp size and number. A double-blind, randomized, controlled trial evaluating the efficacy of sulindac plus an epidermal growth factor receptor inhibitor, erlotinib, versus placebo in FAP or AFAP patients with duodenal polyps suggested that erlotinib has the potential to inhibit duodenal polyps in FAP patients. An ongoing trial will determine whether lower doses of erlotinib alone will significantly reduce duodenal polyp burden. Aspirin use (600 mg daily) was shown to have a preventive effect on cancer incidence in Lynch syndrome patients in a large randomized trial; lower doses are being examined in an ongoing study.
  Novel therapies that stimulate the immune system have been evaluated in MMR-deficient tumors, including those related to Lynch syndrome. The dense immune infiltration and cytokine-rich environment in MMR-deficient tumors may improve clinical outcomes. A critical pathway responsible for mediating tumor-induced immune suppression is the programmed cell death-1 (PD-1)–mediated checkpoint pathway. Two phase 2 studies using anti–PD-1 immune checkpoint inhibitors (pembrolizumab and nivolumab) demonstrated favorable outcomes, including progression-free survival, radiographic response rates, and disease control rates in metastatic CRC with MMR deficiency and MSI that had progressed on prior cytotoxic chemotherapy. Pembrolizumab has shown similar benefit in other noncolorectal cancers with MMR deficiency and MSI, but not in tumors that are microsatellite stable.
- Psychosocial and Behavioral Issues
  Psychosocial factors influence decisions about genetic testing for inherited cancer risk and risk-management strategies. Uptake of genetic counseling and genetic testing for Lynch syndrome and FAP varies widely across studies. Factors that have been associated with genetic counseling and testing uptake in Lynch syndrome families include having children, the number of affected relatives, perceived risk of developing CRC, and frequency of thoughts about CRC. Psychological studies have shown low levels of distress, particularly in the long term, after genetic testing for Lynch syndrome in both carriers and noncarriers. However, other studies have demonstrated the possibility of increased distress following genetic testing for FAP. Colon and gynecologic cancer screening rates have been shown to increase or be maintained among carriers of MMR pathogenic variants within the year after disclosure of results, while screening rates decrease among noncarriers. The latter is expected as the screening recommendations for unaffected individuals are those that apply to the general population. Studies measuring quality-of-life variables in FAP patients show normal-range results; however, these studies suggest that risk-reducing surgery for FAP may have negative quality-of-life effects for at least some proportion of those affected. Patients' communication with their family members about an inherited risk of CRC is complex; gender, age, and the degree of relatedness are some elements that affect disclosure of this information. Research is ongoing to better understand and address psychosocial and behavioral issues in high-risk families.

## Introduction

Colorectal cancer (CRC) is the third most commonly diagnosed cancer in both men and women.

Estimated new cases and deaths from CRC in 2024 in the United States:[1]

- New cases: 152,810.
- Deaths: 53,010.

About 75% of patients with CRC have sporadic disease with no apparent evidence of having inherited the disorder. The remaining 10% to 30% of patients have a family history of CRC that suggests a hereditary contribution, common exposures or shared risk factors among family members, or a combination of both.[2] Pathogenic variants in high-penetrance genes have been identified as the cause of inherited cancer risk in some colon cancer–prone families; these are estimated to account for only 5% to 6% of CRC cases overall.[3,4]

In addition, pathogenic variants in lower-penetrance genes may contribute to familial colon cancer risk. In such cases, gene-gene and gene-environment interactions may contribute to the development of CRC.

(Refer to the PDQ summaries on Colorectal Cancer Screening; Colorectal Cancer Prevention; Colon Cancer Treatment; and Rectal Cancer Treatment for more information about sporadic CRC.)

### Colorectal Polyps as Precursors to Colorectal Cancer (CRC)

Colorectal tumors present with a broad spectrum of neoplasms, ranging from benign growths to invasive cancer, and are predominantly epithelial-derived tumors (i.e., adenomas or adenocarcinomas).

Transformation of any polyp into cancer goes through the adenoma-carcinoma sequence. Polyps that have traditionally been considered nonneoplastic include those of the hyperplastic, juvenile, hamartomatous, inflammatory, and lymphoid types. However, in certain circumstances, hamartomatous and juvenile polyps can progress into cancer.

Research, however, does suggest a substantial risk of colon cancer in individuals with juvenile polyposis syndrome and Peutz-Jeghers syndrome, although the nonadenomatous polyps associated with these syndromes have historically been viewed as nonneoplastic.[5-7]

Epidemiological studies have shown that a personal history of colon adenomas places one at an increased risk of developing colon cancer.[8]

Two complementary interpretations of this observation are as follows:

1. The adenoma may reflect an innate or acquired tendency of the colon to form tumors.
2. Adenomas are the primary precursor lesion of colon cancer.

More than 95% of CRCs are carcinomas, and about 95% of these are adenocarcinomas. It is well recognized that adenomatous polyps are benign tumors that may undergo malignant transformation. They have been classified into three histological types, with increasing malignant potential: tubular, tubulovillous, and villous. Adenocarcinomas are generally considered to arise from adenomas,[9-13] based upon the following important observations:

1. Benign and malignant tissue occur within colorectal tumors.[14]
2. When patients with adenomas were followed for 20 years, the risk of cancer at the site of the adenoma was 25%, a rate much higher than that expected in the normal population.[15]

The following three characteristics of adenomas are highly correlated with the potential to transform into cancer:[14]

1. Larger size.
2. Villous pathology.
3. The degree of dysplasia within the adenoma.

In addition, removal of adenomatous polyps is associated with reduced CRC incidence.[16,17] While most adenomas are polypoid, flat and depressed lesions may be more prevalent than previously recognized. Large, flat, and depressed lesions may be more likely to be severely dysplastic, although this remains to be clearly proven.[18,19] Specialized techniques may be needed to identify, biopsy, and remove such lesions.[20]

### Family History as a Risk Factor for CRC

Some of the earliest studies of family history of CRC were those of Utah families that reported a higher percentage of deaths from CRC (3.9%) among the first-degree relatives (FDRs) of patients who had died from CRC than among sex-matched and age-matched controls (1.2%).[21] This difference has since been replicated in numerous studies that have consistently found that FDRs of affected cases are themselves at a twofold to threefold increased risk of CRC. Despite the various study designs (case-control, cohort), sampling frames, sample sizes, methods of data verification, analytic methods, and countries where the studies originated, the magnitude of risk is consistent.[22-27]

A systematic review and meta-analysis of familial CRC risk has been reported.[28] Of 24 studies included in the analysis, all but one reported an increased risk of CRC if there was an affected FDR. The relative risk (RR) for CRC in the pooled study was 2.25 (95% confidence interval [CI], 2.00–2.53) if there was an affected FDR. In 8 of 11 studies, if the index cancer arose in the colon, the risk was slightly higher than if it arose in the rectum. The pooled analysis revealed an RR in relatives of colon and rectal cancer patients of 2.42 (95% CI, 2.20–2.65) and 1.89 (95% CI, 1.62–2.21), respectively. The analysis did not reveal a difference in RR for colon cancer based on location of the tumor (right side vs. left side).

The number of affected family members and age at cancer diagnosis correlated with the CRC risk. In studies reporting more than one FDR with CRC, the RR was 3.76 (95% CI, 2.56–5.51). The highest RR was observed when the index case was diagnosed in individuals younger than 45 years (RR, 3.87; 95% CI, 2.40–6.22) compared with family members of index cases diagnosed at ages 45 to 59 years (RR, 2.25; 95% CI, 1.85–2.72), and to family members of index cases diagnosed at age 60 years or older (RR, 1.82; 95% CI, 1.47–2.25). In this meta-analysis, the familial risk of CRC associated with adenoma in an FDR was analyzed. The pooled analysis demonstrated an RR for CRC of 1.99 (95% CI, 1.55–2.55) in individuals who had an FDR with an adenoma.[28] This finding has been corroborated.[29] Other studies have reported that age at diagnosis of the adenoma influences the CRC risk, with younger age at adenoma diagnosis associated with higher RR.[30,31] As with any meta-analysis, there could be potential biases that might affect the results of the analysis, including incomplete and nonrandom ascertainment of studies included; publication bias; and heterogeneity between studies relative to design, target populations, and control selection. This study is reinforcement that there are significant associations between familial CRC risk, age at diagnosis of both CRC and adenomas, and multiplicity of affected family members.

Table 1. Estimated Relative and Absolute Risk of Developing Colorectal Cancer (CRC)

Family History | Relative Risk of CRC [28] | Absolute Risk (%) of CRC by Age 79 y^a^
No family history | 1 | 4^a^
One FDR with CRC | 2.3 (95% CI, 2.0–2.5) | 9^b^
More than one FDR with CRC | 4.3 (95% CI, 3.0–6.1) | 16^b^
One affected FDR diagnosed with CRC before age 45 y | 3.9 (95% CI, 2.4–6.2) | 15^b^
One FDR with colorectal adenoma | 2.0 (95% CI, 1.6–2.6) | 8^b^

CI = confidence interval; FDR = first-degree relative.

^a^Data from the Surveillance, Epidemiology, and End Results Program database.

^b^The absolute risks of CRC for individuals with affected relatives was calculated using the relative risks for CRC [28] and the absolute risk of CRC by age 79 years^a^.

When the family history includes two or more relatives with CRC, the possibility of a genetic syndrome is increased substantially. The first step in this evaluation is a detailed review of the family history to determine the number of relatives affected, their relationship to each other, the age at which the CRC was diagnosed, the presence of multiple primary CRCs, and the presence of any other cancers (e.g., endometrial) consistent with an inherited CRC syndrome. (Refer to the Major Genetic Syndromes section of this summary for more information.) Computer models are now available to estimate the probability of developing CRC.[32] These models can be helpful in providing genetic counseling to individuals at average risk and high risk of developing cancer. In addition, at least three validated models are also available for predicting the probability of carrying a pathogenic variant in a mismatch repair (MMR) gene.[33-35]

Figure 1 shows the proportion of CRC cases that arise in various family risk settings.[36]

Figure 1. The fractions of colon cancer cases that arise in various family risk settings. Reprinted from Gastroenterology, Vol. 119, No. 3, Randall W. Burt, Colon Cancer Screening, Pages 837-853, Copyright (2000), with permission from Elsevier.

Pie chart showing the fractions of colon cancer cases that arise in various family risk settings. The majority of colon cancer cases diagnosed in these settings are sporadic. The remaining cancer cases are: cases with familial risk (10%–30%); Lynch syndrome (hereditary nonpolyposis colorectal cancer) (2%–3%); familial adenomatous polyposis (&lt;1%); and hamartomatous polyposis syndrome (&lt;0.1%).

### Inheritance of CRC Predisposition

Several genes associated with CRC risk have been identified; these are described in detail in the Colon Cancer Genes section of this summary. Almost all pathogenic variants known to cause a predisposition to CRC are inherited in an autosomal dominant fashion.[37] One example of autosomal recessive inheritance, MUTYH-associated polyposis (MAP), has been identified. (Refer to the MUTYH-Associated Polyposis [MAP] section of this summary for more information.) Thus, the family characteristics that suggest autosomal dominant inheritance of cancer predisposition are important indicators of high risk and of the possible presence of a cancer-predisposing pathogenic variant. These include the following:

1. Vertical transmission of cancer predisposition in autosomal dominant conditions. (Vertical transmission refers to the presence of a genetic predisposition in sequential generations.)
2. Inheritance risk of 50% for both male and female children. When a parent carries an autosomal dominant genetic predisposition, each child has a 50% chance of inheriting the predisposition. The risk is the same for both male and female children.
3. Other clinical characteristics also suggest the presence of a hereditary CRC syndrome:
  - Cancers in people with a hereditary predisposition typically occur at an earlier age than in sporadic cases.[38]
  - A predisposition to CRC may include a predisposition to other cancers, such as endometrial cancer, as detailed in the Major Genetic Syndromes section of this summary.
  - In addition, two or more primary cancers may occur in a single individual. These could be multiple primary cancers of the same type (e.g., two separate primary CRCs) or primary cancer of different types (e.g., colorectal and endometrial cancer in the same individual).
  - The presence of nonneoplastic extracolonic features may suggest a hereditary colon cancer predisposition syndrome (e.g., congenital hypertrophy of the retinal pigment epithelium and desmoid tumors in familial adenomatous polyposis [FAP]).
  - An uncommon tumor (e.g., adrenocortical carcinoma, sebaceous adenoma or carcinoma, and trichilemmoma) may serve as a clue to the presence of a hereditary cancer syndrome.
  - The presence of multiple polyps may suggest a hereditary colon cancer predisposition syndrome. As susceptibility to oligopolyposis (as few as 10–15 polyps) has become apparent, clinicians, and gastrointestinal endoscopists in particular, may consider multigene (panel) testing of an ever-expanding list of genes associated with CRC. (Refer to Table 2, Genes Associated with a High Susceptibility of Colorectal Cancer, for more information.) Because oligopolyposis also involves diverse pathology (including hamartomas, sessile serrated polyps, and sessile serrated adenomas), careful attention to polyp count and polyp histologies helps to determine whether genetic testing and/or further clinical evaluation is appropriate.

The two most common causes of hereditary CRC are FAP (including AFAP), due to germline pathogenic variants in the APC gene,[39-46] and Lynch syndrome (previously called hereditary nonpolyposis colorectal cancer [HNPCC]), which is caused by germline pathogenic variants in DNA MMR genes.[47-50] (Figure 2 depicts a classic family with Lynch syndrome, highlighting some of the indicators of hereditary CRC that are described above.) Many other families exhibit aggregation of CRC and/or adenomas, but with no apparent association with an identifiable hereditary syndrome, and are known collectively as familial CRC.[37]

Figure 2. Lynch syndrome pedigree. This pedigree shows some of the classic features of a family with Lynch syndrome, including affected family members with colon cancer or endometrial cancer, a young age at onset in some individuals, and incomplete penetrance. Lynch syndrome families may exhibit some or all of these features. Lynch syndrome families may also include individuals with other gastrointestinal, gynecologic, and genitourinary cancers, or other extracolonic cancers. As an autosomal dominant syndrome, Lynch syndrome can be transmitted through maternal or paternal lineages, as depicted in the figure. Because the cancer risk is not 100%, individuals who have Lynch syndrome may not develop cancer, such as the mother of the female with colon cancer diagnosed at age 37 years in this pedigree (called incomplete penetrance).

Pedigree showing some of the classic features of a family with Lynch syndrome across three generations, including transmission occurring through maternal and paternal lineages and the presence of both colon and endometrial cancers.

### Identification of Individuals at High Genetic Risk of CRC

National Comprehensive Cancer Network (NCCN) guidelines are updated annually to help identify patients who are appropriate for referral to cancer genetic counseling services. Furthermore, NCCN also provides cancer surveillance recommendations for hereditary cancer syndromes. The American College of Medical Genetics and Genomics and the National Society of Genetic Counselors have published a comprehensive set of personal/family history criteria to help identify at-risk individuals for referral to cancer genetics risk consultations.[51] These practice guidelines consider tumor types, other specific tumor features, and related criteria that would prompt a genetics referral. The authors state that these guidelines from ACMG/NSGC are intended to maximize referral of appropriate at-risk individuals to cancer genetic counseling services, but they are not meant to provide genetic testing or treatment recommendations. In addition, the authors note other sources that discuss updated/evolving genetic testing criteria for hereditary cancer syndromes (e.g., NCCN), and they acknowledge the increasing role of nongenetics professionals in facilitating genetic testing, especially to guide cancer treatment.[52]

When such persons are identified, options tailored to the patient situation are considered. (Refer to the Major Genetic Syndromes section of this summary for information on specific interventions for individual syndromes.)

At this time, the use of pathogenic variant testing to identify genetic susceptibility to CRC is not recommended as a screening measure in the general population. The rarity of pathogenic variants in CRC-associated genes and the limited sensitivity of current testing strategies render general population testing potentially misleading and not cost-effective.

Rather detailed recommendations for surveillance in FAP and Lynch syndrome have been provided by several organizations representing various medical specialties and societies. These organizations include the following:

- American Cancer Society.[53]
- United States Multisociety (American Gastroenterological Association and American Society for Gastrointestinal Endoscopy) Task Force on Colorectal Cancer.[54]
- American Society of Colon and Rectal Surgeons.[55]
- NCCN.[56]
- Gene Reviews (https://www.ncbi.nlm.nih.gov/gtr/).
- American College of Gastroenterology.[57]
- Society of Gynecologic Oncology and American College of Obstetrics & Gynecology (https://www.sgo.org/wp-content/uploads/2012/09/2014-ACOG-bulletin.pdf).

The evidence bases for recommendations are generally included within the statements or guidelines. In many instances, these guidelines reflect expert opinion resting on studies that are rarely randomized prospective trials.

#### Early-onset CRC

The epidemiology of CRC with regard to age at diagnosis is shifting, with individuals increasingly being diagnosed before age 55 years,[1] often in the absence of polyposis and without a family history of CRC suggesting an inherited cancer syndrome.[58-60] (Refer to the PDQ summary on Colorectal Cancer Prevention for more information about CRC incidence trends in the general population.) One study that examined the prevalence of highly penetrant pathogenic variants in 450 individuals with early-onset CRC (mean age at diagnosis, 42.5 y) and a family history including at least one FDR with colon, endometrial, breast, ovarian, and/or pancreatic cancer identified 75 germline pathogenic or likely pathogenic variants in 72 patients (16%).[58] The spectrum of variants identified included Lynch syndrome and non-Lynch syndrome–associated genes, including several genes that have not traditionally been associated with CRC (e.g., BRCA1/BRCA2, ATM, CHEK2, PALB2, and CDKN2A). Given the high frequency and variety of hereditary cancer syndromes identified, the authors suggested that multigene (panel) testing in this population may be warranted.

In the absence of an additional family or personal history suggestive of Lynch syndrome, isolated cases of CRC diagnosed before age 36 years are uncommonly associated with MMR gene pathogenic variants. One study found MMR pathogenic variants in only 6.5% of such individuals,[59] whereas another study of patients with CRC younger than 50 years with no more than one FDR with CRC found abnormal microsatellite instability (MSI) in 21% of tumors and overrepresentation of defects in the PMS2 and MSH6 genes.[60] Therefore, isolated cases of very early-onset CRC in the absence of polyposis should be offered tumor screening with MSI/immunohistochemistry rather than proceeding directly to germline pathogenic variant analysis.

The use of polygenic risk scores (PRS) is being studied in the context of early-onset CRC in individuals who have tested negative for common CRC susceptibility variants (NCT02863107 (https://www.cancer.gov/clinicaltrials/NCT02863107)), with data from one large analysis [61] demonstrating that the predictive capacity of a 95-gene PRS may be particularly strong in assessing for CRC risk among young individuals (age, <50 y) who lack a family history of CRC in an FDR, and who would otherwise not be selected for early initiation of colonoscopic screening, by current practice.

### Difficulties in Identifying a Family History of CRC Risk

The accuracy and completeness of family history data must be considered when using family history to assess individual risk in clinical practice and when identifying families appropriate for cancer research. A reported family history may be erroneous, or a person may be unaware of relatives with cancer.[62] Increased use of colonoscopy may result in fewer CRCs and more precancerous colon polyps in a family history. Individuals are much less likely to know about their family history of polyps (i.e., type of polyps and total number of polyps in their relatives) than they are to know about their family history of cancer. In addition, small family sizes and premature deaths may limit how informative a family history may be. Also, due to incomplete penetrance, some individuals may carry a genetic predisposition to CRC but do not develop cancer, giving the impression of skipped generations in a family tree.

Accuracy of patient-reported family history of colon cancer has been shown to be good, but it is not optimal. Patient report should be verified by obtaining medical records whenever possible, especially for reproductive tract cancers that may be relevant in identifying risk of Lynch syndrome and less reliably reported by some patients. (Refer to the Accuracy of the family history section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for more information.)

Several approaches are available to evaluate a patient with newly diagnosed CRC who may or may not be suspected of having a cancer genetics syndrome. The clinician may suspect a potential inherited disposition based on the family history and physical exam, and genetic tests are available to confirm these suspicions. The American College of Medical Genetics and Genomics has published guidelines for evaluating patients with suspected colon cancer susceptibility syndromes.[51] The guidelines aim to identify individuals whose clinical features warrant referral for genetics consultation. If an individual has multiple polyps (>20), depending on the histology, specific gene-directed testing can be a useful diagnostic tool. Similarly, if a patient’s clinical presentation is suspicious for Lynch syndrome, germline genetic testing can be directed towards this syndrome. However, diagnosis is more challenging when the clinical picture is less clear. Currently, tumor screening for Lynch syndrome is the most commonly accepted approach. However, increasingly, panels characterizing somatic variants in tumors are being utilized for a variety of clinical decisions.

A priori risk-assessment testing (which models risk based on a variety of factors, such as age at cancer onset and the spectrum of tumors in the family) may be an appropriate alternative in many cases. Application of such risk models does anticipate the use of multigene (panel) testing; however, their exact role remains to be established.

### Molecular Events Associated With Colon Carcinogenesis

Much of our initial understanding of the molecular pathogenesis of CRC derived from rare hereditary CRC syndromes and revealed heterogeneity of CRC both molecularly and clinically. It is well accepted that most CRCs develop from adenomas. The transition from normal epithelium to adenoma to carcinoma is associated with acquired molecular events.[63-65] Presently, CRC can be separated into three categories based on similar molecular genetic features, suggesting divergent pathways of tumorigenesis: chromosomal instability (CIN), MSI, and CpG island methylator phenotype (CIMP). The understanding of the molecular genetic pathways of colorectal tumorigenesis is still evolving, and each new level of understanding has occurred in the context of the preceding level of knowledge. In addition, these pathways emerged from important clinical and histological heterogeneity of colorectal polyps and cancers. Thus, the introduction below captures the chronological evolution of our current understanding of colorectal tumorigenesis.

#### Chromosomal instability (CIN) pathway

Most CRCs develop through the CIN pathway. Key changes in CIN cancers include widespread alterations in chromosome number (aneuploidy) and frequent detectable losses at the molecular level of portions of chromosomes (loss of heterozygosity), such as 5q, 18q, and 17p; and pathogenic variants of the KRAS oncogene. The important genes involved in these chromosome losses are APC (5q), DCC/MADH2/MADH4 (18q), and TP53 (17p).[64,66] These chromosomal losses are indicative of genetic instability at the molecular and chromosomal levels.[65] Among the earliest and most common events in the colorectal tumor progression pathway is loss or pathogenic variant–inactivation of the APC gene. Pathogenic variant–inactivation of APC was first shown to be important to CRC in FAP, a hereditary CRC syndrome in which affected individuals harbor germline APC alterations, resulting in its loss of function and a dramatically increased incidence of colorectal polyps and cancers. Acquired or inherited pathogenic variants of DNA damage-repair genes, for example, base excision repair, nucleotide excision repair, double stranded repair, and MMR, also play a role in predisposing colorectal epithelial cells to pathogenic variants.

#### Microsatellite instability (MSI) pathway

Soon thereafter, a subset (10%–15%) of CRCs was identified that lacked evidence of chromosomal instability but exhibited aberrations in microsatellite repeat sequences,[67,68] a characteristic of tumors in patients with Lynch syndrome.[69] It was later found that hypermethylation of the MLH1 promoter is responsible for many sporadic CRCs with MSI. Germline variants in DNA MMR genes were discovered in patients with Lynch syndrome, whose CRCs frequently displayed MSI. Thus, the microsatellite instability pathway (MSI, sometimes referred to as MIN) was proposed.

The key characteristics of MSI cancers are that they have a largely intact chromosome complement and, as a result of defects in the DNA MMR system, more readily acquire pathogenic variants in important and often unique cancer-associated genes. These types of cancers are detectable at the molecular level by alterations in repeating units of DNA that occur normally throughout the genome, known as DNA microsatellites.

The rate of adenoma-to-carcinoma progression appears to be faster in microsatellite-unstable tumors than in microsatellite-stable tumors.[70] The foundation for this is the repeated reports of interval cancers in patients with recent, normal colonoscopy. Further support for this is seen in the serrated pathway (see below), in which high rates of interval cancer have also been observed.[71,72] Characteristic histological changes, such as increased mucin production, can be seen in tumors that demonstrate MSI, intratumoral T lymphocyte infiltration/Crohn-like reaction, etc., distinguishing the colorectal tumors in this pathway.

The knowledge derived from the study of inherited CRC syndromes has provided important clues regarding the molecular events that mediate tumor initiation and tumor progression in people without germline abnormalities. Among the earliest events in the colorectal tumor progression pathway (both MSI and CIN) is loss of function of the APC gene product.

#### CpG island methylator phenotype (CIMP) and the serrated polyposis pathway

Beginning in the 1980s, studies began reporting an increased risk of CRC in patients with hyperplastic polyposis syndrome (HPS), now referred to as serrated polyposis syndrome (SPS).[6,7,73-78] Only a minority of SPS appear to be familial, but no common germline variant has been identified in these families to date. A comparison of the hyperplastic polyps (HPs) found in SPS patients and controls revealed that SPS polyps are histologically distinct and are similar to previously described serrated adenomas, polyps with features of HPs and adenomatous polyps (APs).[79] This led to observations that these sessile serrated adenomas (SSA) tend to occur in the right colon, where they are frequently large and sessile, and exhibit increased proliferation, dilation and serration of the crypt bases, decreased endocrine cells, and lack of dysplasia.[80]

Further histological characterization of serrated polyps led to subtypes: traditional serrated adenomas (TSA), mixed serrated polyps (MP), and more recently, sessile serrated adenoma/sessile serrated polyp (SSA/SSP).[81] TSAs are characterized by a protuberant morphology, ectopic crypt formation (suggestive of deficient bone morphogenetic protein signaling), and villiform and dysplastic histopathology.[80,82] TSAs are not simply SSAs with dysplasia, and evidence that SSAs are precursors of TSAs is lacking. MPs have overlapping features of HPs, SSAs, and TSAs.

In colonoscopy screening studies, large serrated polyps were strongly and independently associated with the development of advanced colorectal neoplasms, while left-sided HPs were not. The term SSA has been a concern to clinicians as these characteristically lack nuclear atypia, the traditional hallmark of adenomas, but rather are termed adenomas due to other architectural features. The classification of SSA is supported by the knowledge that the molecular characteristics denote an increased cancer risk.[79,83,84]

While APs in Lynch syndrome patients can exhibit MSI, sporadic adenomas rarely do. However, serrated polyps with dysplasia can exhibit MSI with hypermethylation of the MLH1 promoter. Large (>1 cm) serrated polyps carry greater cancer risk than do conventional hyperplastic polyps and, when developing into cancers, characteristically exhibit MSI.[82,85-87] In a review of resected serrated polyps with a malignant focus, all of the polyps originated in the right colon and were SSAs.[85] The malignant foci were MSI and demonstrated loss of MLH1 immunoreactivity, suggesting an association between SSAs and sporadic MSI colon cancers.

The MSI seen in sporadic CRCs is due to hypermethylation of the promoter of MLH1, which abrogates its expression. As promoter regions of other tumor suppressor genes were “silenced” through hypermethylation, cancer genome studies of CRC ensued. These showed a consistent pattern of hypermethylation in the evaluated genes in approximately 50% of CRCs.[88] Studies of larger numbers of unselected CRC patients show that a minority of CRCs (20%–30%) demonstrate CIMP, defined as hypermethylation of two or more of the CpG islands in MINT1, MINT2, MINT31, CDKN2A (p16), and MLH1.[89,90] The term CIMP was coined to classify these cancers, which shared clinical features. Early attempts to differentiate CIMP-positive and CIMP-negative CRCs were unsuccessful.[91] However, subsequent studies using unbiased hierarchical cluster analysis of heavily methylated genes in CRCs and a population-based study design successfully identified unique clinical and molecular characteristics supporting a CIMP pathway.[88,92]

CIMP-high CRCs were much more likely (82.1%; P < .0001) to express MSI than were microsatellite-stable CRCs (24.4%; P < .0001).[88] In one study, microsatellite-stable, CIMP-high (>2 CIMP markers mentioned above) colorectal tumors were significantly more associated with BRAF V600E variants, KRAS2 variants, proximal site, higher American Joint Committee on Cancer stage, older patient age, poor differentiation, and mucinous histology than were CIMP-low (<2 CIMP markers mentioned above) colorectal tumors.[88] Microsatellite-unstable, CIMP-high colorectal tumors were significantly more associated with BRAF V600E pathogenic variants, proximal site, older patient age, and absence of KRAS2 pathogenic variants than were microsatellite unstable, CIMP-low tumors.[88] There was a significantly greater presence of BRAF V600E pathogenic variants in CIMP-high colorectal tumors regardless of MSI.[88] Thus, unlike a previous study that questioned the biological significance of CIMP once unstable colorectal tumors were excluded,[91] this study demonstrated several clinicopathologic variables were indeed associated with CIMP in microsatellite-stable and microsatellite-unstable colorectal tumors.[88]

Studies of polyps revealed CIMP-positive polyps in SPS patients and most frequently in right-sided SSAs.[72,93-96] More recently, a hotspot BRAF pathogenic variant (V600E) was found to be common in MSI colon cancers and serrated polyps.[97-99] A BRAF pathogenic variant is absent in CRCs from Lynch syndrome patients and is rare in sporadic adenomatous colorectal polyps, but it is present in the vast majority of serrated polyps, especially SSAs.[94,96,100-102] CIMP positivity is commonly found in microvesicular hyperplastic polyps (MVHP), suggesting progression of MVHP to SSA and then to colon cancer.[94]

#### Conclusion

The characterization of CIMP CRCs and evidence that MSI occurs later in the adenoma-carcinoma sequence leads to modification of the previous colorectal tumorigenesis model, which was comprised of two pathways: MSI (MIN) and CIN. There is much overlap between the MSI and CIMP pathways. At the heart of the CIMP pathway are serrated polyps harboring BRAF pathogenic variants. The CIN pathway is characterized by AP precursors of which the vast majority harbor APC pathogenic variants that occur early in the pathway.

### References

American Cancer Society: Cancer Facts and Figures 2024. American Cancer Society, 2024. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2024/2024-cancer-facts-and-figures-acs.pdf). Last accessed December 30, 2024.
Kanth P, Grimmett J, Champine M, et al.: Hereditary Colorectal Polyposis and Cancer Syndromes: A Primer on Diagnosis and Management. Am J Gastroenterol 112 (10): 1509-1525, 2017.28786406
Lynch HT, Smyrk TC, Watson P, et al.: Genetics, natural history, tumor spectrum, and pathology of hereditary nonpolyposis colorectal cancer: an updated review. Gastroenterology 104 (5): 1535-49, 1993.8482467 93246141
Rustgi AK: The genetics of hereditary colon cancer. Genes Dev 21 (20): 2525-38, 2007.17938238
Howe JR, Mitros FA, Summers RW: The risk of gastrointestinal carcinoma in familial juvenile polyposis. Ann Surg Oncol 5 (8): 751-6, 1998.9869523 99084868
Jeevaratnam P, Cottier DS, Browett PJ, et al.: Familial giant hyperplastic polyposis predisposing to colorectal cancer: a new hereditary bowel cancer syndrome. J Pathol 179 (1): 20-5, 1996.8691339 96296836
Rashid A, Houlihan PS, Booker S, et al.: Phenotypic and molecular characteristics of hyperplastic polyposis. Gastroenterology 119 (2): 323-32, 2000.10930367 20389968
Neugut AI, Jacobson JS, DeVivo I: Epidemiology of colorectal adenomatous polyps. Cancer Epidemiol Biomarkers Prev 2 (2): 159-76, 1993 Mar-Apr.8467251 93222753
Shinya H, Wolff WI: Morphology, anatomic distribution and cancer potential of colonic polyps. Ann Surg 190 (6): 679-83, 1979.518167 80086667
Fenoglio CM, Lane N: The anatomical precursor of colorectal carcinoma. Cancer 34 (3): suppl:819-23, 1974.4854649 74308161
Morson B: President's address. The polyp-cancer sequence in the large bowel. Proc R Soc Med 67 (6): 451-7, 1974.4853754 74305893
Muto T, Bussey HJ, Morson BC: The evolution of cancer of the colon and rectum. Cancer 36 (6): 2251-70, 1975.1203876 76090194
Stryker SJ, Wolff BG, Culp CE, et al.: Natural history of untreated colonic polyps. Gastroenterology 93 (5): 1009-13, 1987.3653628 88005646
O'Brien MJ, Winawer SJ, Zauber AG, et al.: The National Polyp Study. Patient and polyp characteristics associated with high-grade dysplasia in colorectal adenomas. Gastroenterology 98 (2): 371-9, 1990.2403953 90108551
Winawer SJ, Stewart ET, Zauber AG, et al.: A comparison of colonoscopy and double-contrast barium enema for surveillance after polypectomy. National Polyp Study Work Group. N Engl J Med 342 (24): 1766-72, 2000.10852998 20294789
Winawer SJ, Zauber AG, Ho MN, et al.: Prevention of colorectal cancer by colonoscopic polypectomy. The National Polyp Study Workgroup. N Engl J Med 329 (27): 1977-81, 1993.8247072 94067258
Müller AD, Sonnenberg A: Prevention of colorectal cancer by flexible endoscopy and polypectomy. A case-control study of 32,702 veterans. Ann Intern Med 123 (12): 904-10, 1995.7486484 96072645
O'brien MJ, Winawer SJ, Zauber AG, et al.: Flat adenomas in the National Polyp Study: is there increased risk for high-grade dysplasia initially or during surveillance? Clin Gastroenterol Hepatol 2 (10): 905-11, 2004.15476154
Zauber AG, O'Brien MJ, Winawer SJ: On finding flat adenomas: is the search worth the gain? Gastroenterology 122 (3): 839-40, 2002.11878297 21867093
Rembacken BJ, Fujii T, Cairns A, et al.: Flat and depressed colonic neoplasms: a prospective study of 1000 colonoscopies in the UK. Lancet 355 (9211): 1211-4, 2000.10770302 20231071
Woolf CM: A genetic study of carcinoma of the large intestine. Am J Hum Genet 10 (1): 42-7, 1958.13520697
Fuchs CS, Giovannucci EL, Colditz GA, et al.: A prospective study of family history and the risk of colorectal cancer. N Engl J Med 331 (25): 1669-74, 1994.7969357 95059324
Slattery ML, Kerber RA: Family history of cancer and colon cancer risk: the Utah Population Database. J Natl Cancer Inst 86 (21): 1618-26, 1994.7932826 95018341
Negri E, Braga C, La Vecchia C, et al.: Family history of cancer and risk of colorectal cancer in Italy. Br J Cancer 77 (1): 174-9, 1998.9459165 98119253
St John DJ, McDermott FT, Hopper JL, et al.: Cancer risk in relatives of patients with common colorectal cancer. Ann Intern Med 118 (10): 785-90, 1993.8470852 93228271
Duncan JL, Kyle J: Family incidence of carcinoma of the colon and rectum in north-east Scotland. Gut 23 (2): 169-71, 1982.7068040 82165653
Rozen P, Fireman Z, Figer A, et al.: Family history of colorectal cancer as a marker of potential malignancy within a screening program. Cancer 60 (2): 248-54, 1987.3036327 87243872
Johns LE, Houlston RS: A systematic review and meta-analysis of familial colorectal cancer risk. Am J Gastroenterol 96 (10): 2992-3003, 2001.11693338 21544698
Cottet V, Pariente A, Nalet B, et al.: Colonoscopic screening of first-degree relatives of patients with large adenomas: increased risk of colorectal tumors. Gastroenterology 133 (4): 1086-92, 2007.17919484
Winawer SJ, Zauber AG, Gerdes H, et al.: Risk of colorectal cancer in the families of patients with adenomatous polyps. National Polyp Study Workgroup. N Engl J Med 334 (2): 82-7, 1996.8531963 96127955
Ahsan H, Neugut AI, Garbowski GC, et al.: Family history of colorectal adenomatous polyps and increased risk for colorectal cancer. Ann Intern Med 128 (11): 900-5, 1998.9634428 98285333
Win AK, Macinnis RJ, Hopper JL, et al.: Risk prediction models for colorectal cancer: a review. Cancer Epidemiol Biomarkers Prev 21 (3): 398-410, 2012.22169185
Chen S, Wang W, Lee S, et al.: Prediction of germline mutations and cancer risk in the Lynch syndrome. JAMA 296 (12): 1479-87, 2006.17003396
Balmaña J, Stockwell DH, Steyerberg EW, et al.: Prediction of MLH1 and MSH2 mutations in Lynch syndrome. JAMA 296 (12): 1469-78, 2006.17003395
Barnetson RA, Tenesa A, Farrington SM, et al.: Identification and survival of carriers of mutations in DNA mismatch-repair genes in colon cancer. N Engl J Med 354 (26): 2751-63, 2006.16807412
Burt RW: Colon cancer screening. Gastroenterology 119 (3): 837-53, 2000.10982778
Burt RW, Petersen GM: Familial colorectal cancer: diagnosis and management. In: Young GP, Rozen P, Levin B, eds.: Prevention and Early Detection of Colorectal Cancer. WB Saunders, 1996, pp 171-194.
Mork ME, You YN, Ying J, et al.: High Prevalence of Hereditary Cancer Syndromes in Adolescents and Young Adults With Colorectal Cancer. J Clin Oncol 33 (31): 3544-9, 2015.26195711
Kinzler KW, Nilbert MC, Su LK, et al.: Identification of FAP locus genes from chromosome 5q21. Science 253 (5020): 661-5, 1991.1651562 91335210
Groden J, Thliveris A, Samowitz W, et al.: Identification and characterization of the familial adenomatous polyposis coli gene. Cell 66 (3): 589-600, 1991.1651174 91330306
Leppert M, Burt R, Hughes JP, et al.: Genetic analysis of an inherited predisposition to colon cancer in a family with a variable number of adenomatous polyps. N Engl J Med 322 (13): 904-8, 1990.2156161 90190770
Spirio L, Olschwang S, Groden J, et al.: Alleles of the APC gene: an attenuated form of familial polyposis. Cell 75 (5): 951-7, 1993.8252630 94073973
Brensinger JD, Laken SJ, Luce MC, et al.: Variable phenotype of familial adenomatous polyposis in pedigrees with 3' mutation in the APC gene. Gut 43 (4): 548-52, 1998.9824584 99071229
Soravia C, Berk T, Madlensky L, et al.: Genotype-phenotype correlations in attenuated adenomatous polyposis coli. Am J Hum Genet 62 (6): 1290-301, 1998.9585611 98254449
Pedemonte S, Sciallero S, Gismondi V, et al.: Novel germline APC variants in patients with multiple adenomas. Genes Chromosomes Cancer 22 (4): 257-67, 1998.9669663 98332326
Sieber OM, Lamlum H, Crabtree MD, et al.: Whole-gene APC deletions cause classical familial adenomatous polyposis, but not attenuated polyposis or "multiple" colorectal adenomas. Proc Natl Acad Sci U S A 99 (5): 2954-8, 2002.11867715 21874093
Leach FS, Nicolaides NC, Papadopoulos N, et al.: Mutations of a mutS homolog in hereditary nonpolyposis colorectal cancer. Cell 75 (6): 1215-25, 1993.8261515 94084796
Papadopoulos N, Nicolaides NC, Wei YF, et al.: Mutation of a mutL homolog in hereditary colon cancer. Science 263 (5153): 1625-9, 1994.8128251 94174309
Nicolaides NC, Papadopoulos N, Liu B, et al.: Mutations of two PMS homologues in hereditary nonpolyposis colon cancer. Nature 371 (6492): 75-80, 1994.8072530 94352394
Miyaki M, Konishi M, Tanaka K, et al.: Germline mutation of MSH6 as the cause of hereditary nonpolyposis colorectal cancer. Nat Genet 17 (3): 271-2, 1997.9354786 98016406
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Smith RA, Cokkinides V, Eyre HJ: American Cancer Society guidelines for the early detection of cancer, 2006. CA Cancer J Clin 56 (1): 11-25; quiz 49-50, 2006 Jan-Feb.16449183
Winawer S, Fletcher R, Rex D, et al.: Colorectal cancer screening and surveillance: clinical guidelines and rationale-Update based on new evidence. Gastroenterology 124 (2): 544-60, 2003.12557158 22444234
Church J, Simmang C; Standards Task Force, et al.: Practice parameters for the treatment of patients with dominantly inherited colorectal cancer (familial adenomatous polyposis and hereditary nonpolyposis colorectal cancer). Dis Colon Rectum 46 (8): 1001-12, 2003.12907889
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal, Endometrial, and Gastric. Version 3.2024. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2024. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_ceg.pdf) Last accessed December 13, 2024.
Syngal S, Brand RE, Church JM, et al.: ACG clinical guideline: Genetic testing and management of hereditary gastrointestinal cancer syndromes. Am J Gastroenterol 110 (2): 223-62; quiz 263, 2015.25645574
Pearlman R, Frankel WL, Swanson B, et al.: Prevalence and Spectrum of Germline Cancer Susceptibility Gene Mutations Among Patients With Early-Onset Colorectal Cancer. JAMA Oncol 3 (4): 464-471, 2017.27978560
Jasperson KW, Vu TM, Schwab AL, et al.: Evaluating Lynch syndrome in very early onset colorectal cancer probands without apparent polyposis. Fam Cancer 9 (2): 99-107, 2010.19731080
Goel A, Nagasaka T, Spiegel J, et al.: Low frequency of Lynch syndrome among young patients with non-familial colorectal cancer. Clin Gastroenterol Hepatol 8 (11): 966-71, 2010.20655395
Archambault AN, Su YR, Jeon J, et al.: Cumulative Burden of Colorectal Cancer-Associated Genetic Variants Is More Strongly Associated With Early-Onset vs Late-Onset Cancer. Gastroenterology 158 (5): 1274-1286.e12, 2020.31866242
Glanz K, Grove J, Le Marchand L, et al.: Underreporting of family history of colon cancer: correlates and implications. Cancer Epidemiol Biomarkers Prev 8 (7): 635-9, 1999.10428202 99355156
Fearon ER, Vogelstein B: A genetic model for colorectal tumorigenesis. Cell 61 (5): 759-67, 1990.2188735 90263101
Vogelstein B, Kinzler KW: The multistep nature of cancer. Trends Genet 9 (4): 138-41, 1993.8516849 93296885
Lengauer C, Kinzler KW, Vogelstein B: Genetic instabilities in human cancers. Nature 396 (6712): 643-9, 1998.9872311 99087316
Kinzler KW, Vogelstein B: Colorectal tumors. In: Vogelstein B, Kinzler KW, eds.: The Genetic Basis of Human Cancer. 2nd ed. McGraw-Hill, 2002, pp 583-612.
Thibodeau SN, Bren G, Schaid D: Microsatellite instability in cancer of the proximal colon. Science 260 (5109): 816-9, 1993.8484122
Ionov Y, Peinado MA, Malkhosyan S, et al.: Ubiquitous somatic mutations in simple repeated sequences reveal a new mechanism for colonic carcinogenesis. Nature 363 (6429): 558-61, 1993.8505985
Peltomäki P, Lothe RA, Aaltonen LA, et al.: Microsatellite instability is associated with tumors that characterize the hereditary non-polyposis colorectal carcinoma syndrome. Cancer Res 53 (24): 5853-5, 1993.8261393
Jass JR, Cottier DS, Pokos V, et al.: Mixed epithelial polyps in association with hereditary non-polyposis colorectal cancer providing an alternative pathway of cancer histogenesis. Pathology 29 (1): 28-33, 1997.9094174
Jass JR: Serrated route to colorectal cancer: back street or super highway? J Pathol 193 (3): 283-5, 2001.11241405
Wynter CV, Walsh MD, Higuchi T, et al.: Methylation patterns define two types of hyperplastic polyp associated with colorectal cancer. Gut 53 (4): 573-80, 2004.15016754
Bengoechea O, Martínez-Peñuela JM, Larrínaga B, et al.: Hyperplastic polyposis of the colorectum and adenocarcinoma in a 24-year-old man. Am J Surg Pathol 11 (4): 323-7, 1987.3565675
Hyman NH, Anderson P, Blasyk H: Hyperplastic polyposis and the risk of colorectal cancer. Dis Colon Rectum 47 (12): 2101-4, 2004.15657661
Leggett BA, Devereaux B, Biden K, et al.: Hyperplastic polyposis: association with colorectal cancer. Am J Surg Pathol 25 (2): 177-84, 2001.11176066
McCann BG: A case of metaplastic polyposis of the colon associated with focal adenomatous change and metachronous adenocarcinomas. Histopathology 13 (6): 700-2, 1988.2466756
Place RJ, Simmang CL: Hyperplastic-adenomatous polyposis syndrome. J Am Coll Surg 188 (5): 503-7, 1999.10235578
Koide N, Saito Y, Fujii T, et al.: A case of hyperplastic polyposis of the colon with adenocarcinomas in hyperplastic polyps after long-term follow-up. Endoscopy 34 (6): 499-502, 2002.12048637
Torlakovic E, Snover DC: Serrated adenomatous polyposis in humans. Gastroenterology 110 (3): 748-55, 1996.8608884
Torlakovic EE, Gomez JD, Driman DK, et al.: Sessile serrated adenoma (SSA) vs. traditional serrated adenoma (TSA). Am J Surg Pathol 32 (1): 21-9, 2008.18162766
Snover DC, Jass JR, Fenoglio-Preiser C, et al.: Serrated polyps of the large intestine: a morphologic and molecular review of an evolving concept. Am J Clin Pathol 124 (3): 380-91, 2005.16191506
Lash RH, Genta RM, Schuler CM: Sessile serrated adenomas: prevalence of dysplasia and carcinoma in 2139 patients. J Clin Pathol 63 (8): 681-6, 2010.20547691
Torlakovic E, Skovlund E, Snover DC, et al.: Morphologic reappraisal of serrated colorectal polyps. Am J Surg Pathol 27 (1): 65-81, 2003.12502929
Jass JR, Baker K, Zlobec I, et al.: Advanced colorectal polyps with the molecular and morphological features of serrated polyps and adenomas: concept of a 'fusion' pathway to colorectal cancer. Histopathology 49 (2): 121-31, 2006.16879389
Goldstein NS: Small colonic microsatellite unstable adenocarcinomas and high-grade epithelial dysplasias in sessile serrated adenoma polypectomy specimens: a study of eight cases. Am J Clin Pathol 125 (1): 132-45, 2006.16483002
Lu FI, van Niekerk de W, Owen D, et al.: Longitudinal outcome study of sessile serrated adenomas of the colorectum: an increased risk for subsequent right-sided colorectal carcinoma. Am J Surg Pathol 34 (7): 927-34, 2010.20551824
Schreiner MA, Weiss DG, Lieberman DA: Proximal and large hyperplastic and nondysplastic serrated polyps detected by colonoscopy are associated with neoplasia. Gastroenterology 139 (5): 1497-502, 2010.20633561
Toyota M, Ahuja N, Ohe-Toyota M, et al.: CpG island methylator phenotype in colorectal cancer. Proc Natl Acad Sci U S A 96 (15): 8681-6, 1999.10411935
Ahuja N, Mohan AL, Li Q, et al.: Association between CpG island methylation and microsatellite instability in colorectal cancer. Cancer Res 57 (16): 3370-4, 1997.9269998
Samowitz WS, Albertsen H, Herrick J, et al.: Evaluation of a large, population-based sample supports a CpG island methylator phenotype in colon cancer. Gastroenterology 129 (3): 837-45, 2005.16143123
Yamashita K, Dai T, Dai Y, et al.: Genetics supersedes epigenetics in colon cancer phenotype. Cancer Cell 4 (2): 121-31, 2003.12957287
Weisenberger DJ, Siegmund KD, Campan M, et al.: CpG island methylator phenotype underlies sporadic microsatellite instability and is tightly associated with BRAF mutation in colorectal cancer. Nat Genet 38 (7): 787-93, 2006.16804544
Chan AO, Issa JP, Morris JS, et al.: Concordant CpG island methylation in hyperplastic polyposis. Am J Pathol 160 (2): 529-36, 2002.11839573
Kambara T, Simms LA, Whitehall VL, et al.: BRAF mutation is associated with DNA methylation in serrated polyps and cancers of the colorectum. Gut 53 (8): 1137-44, 2004.15247181
O'Brien MJ, Yang S, Clebanoff JL, et al.: Hyperplastic (serrated) polyps of the colorectum: relationship of CpG island methylator phenotype and K-ras mutation to location and histologic subtype. Am J Surg Pathol 28 (4): 423-34, 2004.15087661
Yang S, Farraye FA, Mack C, et al.: BRAF and KRAS Mutations in hyperplastic polyps and serrated adenomas of the colorectum: relationship to histology and CpG island methylation status. Am J Surg Pathol 28 (11): 1452-9, 2004.15489648
Chan TL, Zhao W, Leung SY, et al.: BRAF and KRAS mutations in colorectal hyperplastic polyps and serrated adenomas. Cancer Res 63 (16): 4878-81, 2003.12941809
Rajagopalan H, Bardelli A, Lengauer C, et al.: Tumorigenesis: RAF/RAS oncogenes and mismatch-repair status. Nature 418 (6901): 934, 2002.12198537
Yuen ST, Davies H, Chan TL, et al.: Similarity of the phenotypic patterns associated with BRAF and KRAS mutations in colorectal neoplasia. Cancer Res 62 (22): 6451-5, 2002.12438234
Deng G, Bell I, Crawley S, et al.: BRAF mutation is frequently present in sporadic colorectal cancer with methylated hMLH1, but not in hereditary nonpolyposis colorectal cancer. Clin Cancer Res 10 (1 Pt 1): 191-5, 2004.14734469
McGivern A, Wynter CV, Whitehall VL, et al.: Promoter hypermethylation frequency and BRAF mutations distinguish hereditary non-polyposis colon cancer from sporadic MSI-H colon cancer. Fam Cancer 3 (2): 101-7, 2004.15340260
Wang L, Cunningham JM, Winters JL, et al.: BRAF mutations in colon cancer are not likely attributable to defective DNA mismatch repair. Cancer Res 63 (17): 5209-12, 2003.14500346

## Colorectal Cancer Susceptibility Genes

### Major Genes

Major genes are defined as those that are necessary and sufficient for disease causation, with important pathogenic variants (e.g., nonsense, missense, frameshift) of the gene as causal mechanisms. Major genes are typically considered those that are involved in single-gene disorders, and the diseases caused by major genes are often relatively rare. Most pathogenic variants in major genes lead to a very high risk of disease, and environmental contributions are often difficult to recognize.[1] Historically, most major colon cancer susceptibility genes have been identified by linkage analysis using high-risk families; thus, these criteria were fulfilled by definition, as a consequence of the study design.

The functions of the major colorectal (CRC) cancer genes have been reasonably well characterized over the past decade.[2] Tumor suppressor genes constitute the most important class of genes responsible for hereditary cancer syndromes and represent the class of genes responsible for familial adenomatous polyposis (FAP), Lynch syndrome, and juvenile polyposis syndrome (JPS), among others. Table 2 summarizes the genes that confer a substantial risk of CRC, with their corresponding diseases.

Table 2. Genes Associated with a High Susceptibility of Colorectal Cancer

Gene | Syndrome | Hereditary Pattern | Predominant Cancers
APC | FAP, AFAP | Dominant | Colorectal, small bowel, gastric, etc.
TP53 (p53) | Li-Fraumeni | Dominant | Multiple (including colorectal)
STK11 (LKB1) | PJS | Dominant | Multiple (including colorectal, small bowel, pancreas)
PTEN | Cowden | Dominant | Multiple (including colorectal)
BMPR1A, SMAD4 (MADH/DPC4) | JPS | Dominant | Gastric and colorectal
MLH1, MSH2, MSH6, PMS2, EPCAM | Lynch syndrome | Dominant | Multiple (including colorectal, endometrial, and others)
MUTYH (MYH) | MUTYH-associated polyposis | Recessive | Colorectal
POLD1, POLE | PPAP | Dominant | Colorectal, endometrial

FAP = familial adenomatous polyposis; JPS = juvenile polyposis syndrome; PJS = Peutz-Jeghers syndrome; PPAP = polymerase proofreading–associated polyposis.

### De Novo Pathogenic Variant Rate

Until the 1990s, the diagnosis of genetically inherited polyposis syndromes was based on clinical manifestations and family history. Now that some of the genes involved in these syndromes have been identified, a few studies have attempted to estimate the spontaneous pathogenic variant rate (de novo pathogenic variant rate) in these populations. Interestingly, FAP, JPS, Peutz-Jeghers syndrome, Cowden syndrome, and Bannayan-Riley-Ruvalcaba syndrome are all thought to have high rates of spontaneous pathogenic variants, in the 25% to 30% range,[3-5] while estimates of de novo pathogenic variants in the MMR genes associated with Lynch syndrome are thought to be low, in the 0.9% to 5% range.[6-8] These estimates of spontaneous pathogenic variant rates in Lynch syndrome seem to overlap with the estimates of nonpaternity rates in various populations (0.6% to 3.3%),[9-11] making the de novo pathogenic variant rate for Lynch syndrome seem quite low in contrast to the relatively high rates in the other polyposis syndromes.

### Genetic Polymorphisms and CRC Risk

It is widely acknowledged that the familial clustering of colon cancer also occurs outside of the setting of well-characterized colon cancer family syndromes.[12] Based on epidemiological studies, the risk of colon cancer in a first-degree relative (FDR) of an affected individual can increase an individual’s lifetime risk of colon cancer 2-fold to 4.3-fold.[13] The relative risk (RR) and absolute risk of CRC for different family history categories is estimated in Table 1. In addition, the lifetime risk of colon cancer also increases in FDRs of individuals with colon adenomas.[14] The magnitude of risk depends on the age at diagnosis of the index case, the degree of relatedness of the index case to the at-risk case, and the number of affected relatives. It is currently believed that many of the moderate- and low-risk cases are influenced by alterations in single low-penetrance genes or combinations of low-penetrance genes.[15] Given the public health impact of identifying the etiology of this increased risk, an intense search for the responsible genes is under way.

Each locus would be expected to have a relatively small effect on CRC risk and would not produce the dramatic familial aggregation seen in Lynch syndrome or FAP. However, in combination with other common genetic loci and/or environmental factors, variants of this kind might significantly alter CRC risk. These types of genetic variations are often referred to as polymorphisms. Most loci that are polymorphic have no influence on disease risk or human traits (benign polymorphisms), while those that are associated with a difference in risk of disease or a human trait (however subtle) are sometimes termed disease-associated polymorphisms or functionally relevant polymorphisms. When such variation involves changes in single nucleotides of DNA they are referred to as single nucleotide variants (SNVs).

Several genome-wide association studies (GWAS) have been conducted with relatively large, unselected series of patients with CRC, who have been evaluated for patterns of polymorphisms in candidate and anonymous genes throughout the genome.[16-19] The use of genome-wide scans in thousands of CRC cases and controls has led to the discovery of multiple common, low-risk CRC SNVs, which can be found in the National Human Genome Research Institute GWAS catalog (https://www.ebi.ac.uk/gwas/). For more information on GWAS, see Cancer Genetics Overview.

A goal of these studies has been to identify SNVs that may confer mildly increased CRC risks. This risk stratification could potentially enhance usability of CRC screening by influencing patient decision making regarding the ages to begin/end CRC screening and the amount of time between screening studies. There is increasing interest about using SNVs to expand germline risk assessment. This could be expanded from only searching for monogenic forms of CRC predisposition with high-/moderate-penetrance to searching for forms of CRC predisposition with polygenic risk, which may have broader applicability in the general population. Additionally, multiple studies have examined if polygenic risk scores (PRS) can be used to personalize CRC risk assessment in individuals with average risk of developing CRC.[20,21] While the growing body of data on CRC risk SNVs and PRS have been promising, PRS are not currently used in routine clinical settings and are not considered clinically actionable to guide the use of CRC screening procedures. Formal implementation studies are warranted to analyze how PRS can guide CRC risk assessment and screening in routine clinical care.

### APC I1307K

The APC I1307K polymorphism deserves special mention, given that it is commonly identified in individuals of Ashkenazi Jewish ancestry undergoing multigene (panel) testing [22,23] and is associated with an increased risk of CRC; however, it does not cause colonic polyposis. The I1307K polymorphism occurs almost exclusively in people of Ashkenazi Jewish descent and results in a twofold increased risk of colonic adenomas and adenocarcinomas compared with the general population.[24,25] The I1307K polymorphism results from a transition from T to A at nucleotide 3920 in the APC gene and appears to create a region of hypermutability by virtue of the fact that this results in an A_8_ microsatellite coding sequence.[24] Although clinical assays to assess for the APC I1307K polymorphism are currently available, the associated CRC risk is not high enough to support their routine use. Based on currently available data, it is not yet known whether the I1307K carrier status should guide decisions regarding the age to initiate screening, the frequency of screening, or the choice of screening strategy.

### References

Caporaso N, Goldstein A: Cancer genes: single and susceptibility: exposing the difference. Pharmacogenetics 5 (2): 59-63, 1995.7663529 95392587
Vogelstein B, Kinzler KW: Cancer genes and the pathways they control. Nat Med 10 (8): 789-99, 2004.15286780
Aretz S, Uhlhaas S, Caspari R, et al.: Frequency and parental origin of de novo APC mutations in familial adenomatous polyposis. Eur J Hum Genet 12 (1): 52-8, 2004.14523376
Westerman AM, Entius MM, Boor PP, et al.: Novel mutations in the LKB1/STK11 gene in Dutch Peutz-Jeghers families. Hum Mutat 13 (6): 476-81, 1999.10408777 99335262
Schreibman IR, Baker M, Amos C, et al.: The hamartomatous polyposis syndromes: a clinical and molecular review. Am J Gastroenterol 100 (2): 476-90, 2005.15667510
Morak M, Laner A, Scholz M, et al.: Report on de-novo mutation in the MSH2 gene as a rare event in hereditary nonpolyposis colorectal cancer. Eur J Gastroenterol Hepatol 20 (11): 1101-5, 2008.19047842
Plasilova M, Zhang J, Okhowat R, et al.: A de novo MLH1 germ line mutation in a 31-year-old colorectal cancer patient. Genes Chromosomes Cancer 45 (12): 1106-10, 2006.16955466
Win AK, Jenkins MA, Buchanan DD, et al.: Determining the frequency of de novo germline mutations in DNA mismatch repair genes. J Med Genet 48 (8): 530-4, 2011.21636617
Anderson KG: How well does paternity confidence match actual paternity? Evidence from worldwide nonpaternity rates. Curr Anthropol 47 (3): 513-20, 2006. Also available online (http://www.jstor.org/stable/10.1086/504167). Last accessed May 24, 2024.
Sasse G, Müller H, Chakraborty R, et al.: Estimating the frequency of nonpaternity in Switzerland. Hum Hered 44 (6): 337-43, 1994 Nov-Dec.7860087
Voracek M, Haubner T, Fisher ML: Recent decline in nonpaternity rates: a cross-temporal meta-analysis. Psychol Rep 103 (3): 799-811, 2008.19320216
Burt RW, Bishop DT, Lynch HT, et al.: Risk and surveillance of individuals with heritable factors for colorectal cancer. WHO Collaborating Centre for the Prevention of Colorectal Cancer. Bull World Health Organ 68 (5): 655-65, 1990.2289301
Butterworth AS, Higgins JP, Pharoah P: Relative and absolute risk of colorectal cancer for individuals with a family history: a meta-analysis. Eur J Cancer 42 (2): 216-27, 2006.16338133
Johns LE, Houlston RS: A systematic review and meta-analysis of familial colorectal cancer risk. Am J Gastroenterol 96 (10): 2992-3003, 2001.11693338 21544698
Wei C, Peng B, Han Y, et al.: Mutations of HNRNPA0 and WIF1 predispose members of a large family to multiple cancers. Fam Cancer 14 (2): 297-306, 2015.25716654
Houlston RS, Webb E, Broderick P, et al.: Meta-analysis of genome-wide association data identifies four new susceptibility loci for colorectal cancer. Nat Genet 40 (12): 1426-35, 2008.19011631
Houlston RS, Cheadle J, Dobbins SE, et al.: Meta-analysis of three genome-wide association studies identifies susceptibility loci for colorectal cancer at 1q41, 3q26.2, 12q13.13 and 20q13.33. Nat Genet 42 (11): 973-7, 2010.20972440
Whiffin N, Hosking FJ, Farrington SM, et al.: Identification of susceptibility loci for colorectal cancer in a genome-wide meta-analysis. Hum Mol Genet 23 (17): 4729-37, 2014.24737748
Peters U, Jiao S, Schumacher FR, et al.: Identification of Genetic Susceptibility Loci for Colorectal Tumors in a Genome-Wide Meta-analysis. Gastroenterology 144 (4): 799-807.e24, 2013.23266556
Kastrinos F, Kupfer SS, Gupta S: Colorectal Cancer Risk Assessment and Precision Approaches to Screening: Brave New World or Worlds Apart? Gastroenterology 164 (5): 812-827, 2023.36841490
Sassano M, Mariani M, Quaranta G, et al.: Polygenic risk prediction models for colorectal cancer: a systematic review. BMC Cancer 22 (1): 65, 2022.35030997
Pearlman R, Frankel WL, Swanson B, et al.: Prevalence and Spectrum of Germline Cancer Susceptibility Gene Mutations Among Patients With Early-Onset Colorectal Cancer. JAMA Oncol 3 (4): 464-471, 2017.27978560
Boursi B, Sella T, Liberman E, et al.: The APC p.I1307K polymorphism is a significant risk factor for CRC in average risk Ashkenazi Jews. Eur J Cancer 49 (17): 3680-5, 2013.23896379
Laken SJ, Petersen GM, Gruber SB, et al.: Familial colorectal cancer in Ashkenazim due to a hypermutable tract in APC. Nat Genet 17 (1): 79-83, 1997.9288102 97434216
Lothe RA, Hektoen M, Johnsen H, et al.: The APC gene I1307K variant is rare in Norwegian patients with familial and sporadic colorectal or breast cancer. Cancer Res 58 (14): 2923-4, 1998.9679946

## Major Genetic Syndromes

### Introduction

Originally described in the 1800s and 1900s by their clinical findings, the colon cancer susceptibility syndrome names often reflected the physician or patient and family associated with the syndrome (e.g., Gardner syndrome, Turcot syndrome, Muir-Torre syndrome, Lynch syndrome, Peutz-Jeghers syndrome [PJS], Bannayan-Riley-Ruvalcaba syndrome, and Cowden syndrome). These syndromes were associated with an increased lifetime risk of colorectal adenocarcinoma. They were mostly thought to have autosomal dominant inheritance patterns. Adenomatous colonic polyps were characteristic of the first four, while hamartomas were found to be characteristic in the last three.

With the development of the Human Genome Project and the identification in 1990 of the adenomatous polyposis coli (APC) gene on chromosome 5q, overlap and differences between these familial syndromes became apparent. Gardner syndrome and familial adenomatous polyposis (FAP) were shown to be synonymous, both caused by pathogenic variants in the APC gene. Attenuated FAP (AFAP) was recognized as a syndrome with less adenomas and extraintestinal manifestations due to an APC pathogenic variant at the 3’ or 5’ ends of the gene. MUTYH-associated polyposis (MAP) was recognized as a separate adenomatous polyp syndrome with autosomal recessive inheritance. Once the pathogenic variants were identified, the absolute risk of colorectal cancer (CRC) could be better assessed for carriers of pathogenic variants (refer to Table 3).

Table 3. Absolute Risks of Colorectal Cancer (CRC) for Carriers of Pathogenic Variants in Hereditary CRC Syndromes

Syndrome | Absolute Risk of CRC in Carriers of a Pathogenic Variant
FAP ^a^ | 90% by age 45 y [1]
Attenuated FAP | 69% by age 80 y [2]
Lynch syndrome | 10% to 56% by age 75 y, depending on the gene involved [3-6]
MUTYH-associated polyposis | 35% to 53% [7]
PJS | 39% by age 70 y [8]
JPS | 17% to 68% by age 60 y [9,10]

FAP = familial adenomatous polyposis; JPS = juvenile polyposis syndrome; PJS = Peutz-Jeghers syndrome.

^a^Cancer risk estimates quoted here predate the widespread use of surveillance and prophylactic surgery.

With these discoveries genetic testing and risk management became possible. Genetic testing refers to searching for variants in known cancer susceptibility genes using a variety of techniques. Comprehensive genetic testing includes sequencing the entire coding region of a gene, the intron-exon boundaries (splice sites), and assessment of rearrangements, deletions, or other changes in copy number (with techniques such as multiplex ligation-dependent probe amplification [MLPA] or Southern blot). Despite extensive accumulated experience that helps distinguish pathogenic variants from benign variants and polymorphisms, genetic testing sometimes identifies variants of uncertain significance (VUS) that cannot be used for predictive purposes.

### Familial Adenomatous Polyposis (FAP)

#### Introduction

By 1900, several reports had demonstrated that patients with a large number of polyps (later subclassified as adenomas) were at very high risk of CRC and that the pattern of transmission in families was autosomal dominant. In the 20th century, the adenoma-to-carcinoma progression was confirmed, and FAP was recognized as the prototypical model for this progression.[11] Classic FAP is characterized by numerous (hundreds to thousands) adenomatous polyps in the colon and rectum developing after the first decade of life (refer to Figure 3).

Figure 3. Familial adenomatous polyposis is characterized by multiple (>100) adenomatous polyps in the colon and rectum developing after the first decade of life.

Many polyps protrude from the inner lining of the colon.

There is also a subset of classic FAP that has an attenuated phenotype. AFAP is a heterogeneous clinical entity characterized by fewer adenomatous polyps in the colon and rectum than in classic FAP. (Refer to the Attenuated Familial Adenomatous Polyposis [AFAP] section of this summary for more information.)

FAP is one of the most clearly defined and well understood of the inherited colon cancer syndromes.[1,12,13] It is an autosomal dominant condition, and the reported incidence varies from 1 in 7,000 to 1 in 22,000 live births.[14] The presence of ethnic differences in the prevalence of FAP has been suggested [14] but a large study did not find significant differences in ethnic variation in more than 6,169 individuals with a personal and/or family history of CRC and polyps who were referred for genetic testing at a large reference laboratory.[15] Most cases of FAP result from pathogenic variants in the APC gene on chromosome 5q21. (Refer to the Genetics of FAP section of this summary for more information about the APC gene and genetic testing.)

In addition to a high risk of colon adenomas in FAP patients, various extracolonic manifestations have also been described, including upper gastrointestinal (GI) tract adenomas and adenocarcinomas; fundic gland stomach polyps; nonepithelial benign tumors (osteomas, epidermal cysts, dental abnormalities); desmoid tumors; congenital hypertrophy of retinal pigment epithelium (CHRPE); and malignant tumors (thyroid and brain tumors, hepatoblastoma). Refer to Table 4 for the risks of these extracolonic manifestations in FAP.

Table 4. Extracolonic Tumor Risks in Familial Adenomatous Polyposis

Malignancy | Relative Risk | Absolute Lifetime Risk (%)
Desmoid tumor | 852.0 | 15.0
Duodenal tumors and cancer | 330.8 | 5.0–12.0
Thyroid cancer | 7.6 | 2.0
Brain cancer | 7.0 | 2.0
Ampullary cancer | 123.7 | 1.7
Pancreatic cancer | 4.5 | 1.7
Hepatoblastoma | 847.0 | 1.6
Gastric cancer | Not defined | 0.6^a^

Adapted from Giardiello et al.,[16] Jagelman et al.,[17] Sturt et al.,[18] Lynch et al.,[19] Bülow et al.,[20] Burt et al.,[21] and Galiatsatos et al.[22]

^a^The Leeds Castle Polyposis Group.

FAP has also been known as familial polyposis coli or adenomatous polyposis coli (APC). Gardner syndrome was previously the diagnosis for FAP patients who manifested with colorectal polyposis, osteomas, and soft tissue tumors. However, Gardner syndrome has been shown genetically to be a variant of FAP, and thus the term Gardner syndrome is essentially obsolete in clinical practice.[23]

#### Clinical phenotype

##### Colon adenomas and CRC

Individuals who inherit a pathogenic variant in the APC gene have a very high likelihood of developing colonic adenomas; the risk has been estimated to be more than 90%.[1,12,13] The age at onset of adenomas in the colon is variable, and the median age for the appearance of colorectal adenomas is 16 years.[24] By age 10 years, only 15% of carriers of the APC germline variant manifest adenomas; by age 20 years, the probability rises to 75%; and by age 30 years, 90% will have presented with FAP.[1,12,13,24,25] The exception is AFAP, in which affected individuals typically have fewer colon polyps, which are predominantly in the right colon, and later onset of CRC. (Refer to the Attenuated Familial Adenomatous Polyposis [AFAP] section of this summary for more information.) Without any intervention, most individuals with FAP will develop CRC by the fourth decade of life.[1,12,13] Thus, surveillance and intervention for carriers of an APC pathogenic variant and at-risk individuals have conventionally consisted of annual colonoscopy beginning around puberty for early detection of colonic polyps and to help plan when to perform colectomy.[26,27] (Refer to the Interventions for FAP section of this summary for more information.)

##### Extracolonic manifestations

###### Congenital hypertrophy of the retinal pigment epithelium (CHRPE)

CHRPE are flat, darkly pigmented lesions in the retina that are present in approximately 75% of patients with FAP [28,29] compared with a general population frequency of 1.2%.[30] The lesions are often present at birth or in early childhood and are frequently multiple or bilateral in FAP patients.[31] A study of 17 individuals diagnosed with FAP and 13 at-risk family members reported a sensitivity of the presence of a CHRPE lesion in association with colonic polyps in FAP of 76%, a specificity of 92%, a positive predictive value of 93%, and a negative predictive value of 75%; thus, screening at-risk individuals for CHRPE can be a reasonable method of detecting FAP.[28]

###### Desmoid tumors

Desmoid tumors are proliferative, locally invasive, nonmetastasizing, fibromatous tumors in a collagen matrix. Although they do not metastasize, they can grow very aggressively and be life threatening.[32] Desmoids may occur sporadically, as part of classical FAP, or in a hereditary manner without the colon findings of FAP.[19,33] Desmoids have been associated with hereditary APC pathogenic variants even when not associated with typical adenomatous polyposis of the colon.[33,34]

Most studies have found that 10% of FAP patients develop desmoids, with reported ranges of 8% to 38%. The incidence varies with the means of ascertainment and the location of the pathogenic variant in the APC gene.[33,35,36] APC pathogenic variants occurring between codons 1445 and 1578 have been associated with an increased incidence of desmoid tumors in FAP patients.[34,37-39] Desmoid tumors with a late onset and a milder intestinal polyposis phenotype (hereditary desmoid disease) have been described in patients with pathogenic variants at codon 1924.[33]

A desmoid risk factor scale has been described in an attempt to identify patients who are likely to develop desmoid tumors.[40] The desmoid risk factor scale was based on gender, presence or absence of extracolonic manifestations, family history of desmoids, and genotype, if available. By utilizing this scale, it was possible to stratify FAP patients into low-, medium-, and high-risk groups for developing desmoid tumors. The authors concluded that the desmoid risk factor scale could be used for surgical planning. Validation of the risk factors comprising this scale was supported by a large, multiregistry, retrospective study from Europe.[41]

The natural history of desmoids is variable. Some authors have proposed a model for desmoid tumor formation whereby abnormal fibroblast function leads to mesenteric, plaque-like desmoid precursor lesions, which in some cases occur before surgery and progress to mesenteric fibromatosis after surgical trauma, ultimately giving rise to desmoid tumors.[42] It is estimated that 10% of desmoids resolve, 50% remain stable for prolonged periods, 30% fluctuate, and 10% grow rapidly.[43] Desmoids often occur after surgical or physiological trauma, and both endocrine and genetic factors have been implicated. Approximately 80% of intra-abdominal desmoids in FAP occur after surgical trauma.[44,45]

The desmoids in FAP are often intra-abdominal, may present early, and can lead to intestinal obstruction or infarction and/or obstruction of the ureters.[36] In some series, desmoids are the second most common cause of death after CRC in FAP patients.[46,47] A staging system has been proposed to facilitate the stratification of intra-abdominal desmoids by disease severity.[48] The proposed staging system for intra-abdominal desmoids is as follows: stage I for asymptomatic nongrowing desmoids; stage II for symptomatic nongrowing desmoids of 10 cm or less in maximum diameter; stage III for symptomatic desmoids of 11 cm to 20 cm or for asymptomatic slow-growing desmoids; and stage IV for desmoids larger than 20 cm, or rapidly growing, or with life-threatening complications.[48]

These data suggest that genetic testing could be of value in the medical management of patients with FAP and/or multiple desmoid tumors. Those with APC genotypes predisposing to desmoid formation (e.g., at the 3’ end or codon 1445 of the APC gene) appear to be at high risk of developing desmoids after any surgery, including risk-reducing colectomy and surgical surveillance procedures such as laparoscopy.[35,43,49]

###### Stomach tumors

The most common FAP-related gastric polyps are fundic gland polyps (FGPs). FGPs are often diffuse and not amenable to endoscopic removal. The incidence of FGPs has been estimated to be as high as 60% in patients with FAP, compared with 0.8% to 1.9% in the general population.[20,22,50-54] These polyps consist of distorted fundic glands containing microcysts lined with fundic-type epithelial cells or foveolar mucous cells.[55,56]

The hyperplastic surface epithelium is, by definition, nonneoplastic. Accordingly, FGPs have not been considered precancerous. However, case reports of stomach cancer appearing to arise from FGPs have led to a reexamination of this issue.[22,57] In one FAP series, focal dysplasia was evident in the surface epithelium of FGPs in 25% of patients versus 1% of sporadic FGPs.[56] In a prospective study of patients with FAP undergoing surveillance with esophagogastroduodenoscopy, FGPs were detected in 88% of the patients. Low-grade dysplasia was detected in 38% of these patients, whereas high-grade dysplasia was detected in 3% of these patients. The study's authors recommended that, if a polyp with high-grade dysplasia is identified, polypectomy be considered with repeat endoscopic surveillance in 3 to 6 months.[58]

Complicating the issue of differential diagnosis, FGPs have been increasingly recognized in non-FAP patients consuming proton pump inhibitors (PPIs).[56,59] FGPs in this setting commonly show a PPI effect consisting of congestion of secretory granules in parietal cells, leading to irregular bulging of individual cells into the lumen of glands. To the trained eye, the presence of dysplasia and the concomitant absence of a characteristic PPI effect can be considered highly suggestive of the presence of underlying FAP. The number of FGPs tends to be greater in FAP than that seen in patients consuming PPIs, although there is some overlap.

Gastric adenomas also occur in patients with FAP. The incidence of gastric adenomas in Western patients is reported to be between 2% and 12%, whereas in Japan, incidence is reported to be between 39% and 50%.[60-63] These adenomas can progress to carcinoma. Patients with FAP in Korea and Japan have a threefold to fourfold increased risk of gastric cancer when compared with individuals in the general population in these countries. This finding was not observed in Western populations.[64-68] The increased prevalence of gastric adenomas in Asian patients with FAP may be due to the high prevalence of Helicobacter pylori infections in this population.[61]

More recently, a rise in incidence of gastric adenocarcinoma was observed in a Western FAP database.[69] Alterations in the promoter (1B) of APC were discovered in families with gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS), who express numerous, predominantly fundic gland, gastric polyps restricted to the body and fundus with regions of dysplasia or gastric adenocarcinoma, and no evidence of colorectal or duodenal polyposis. These variants segregated with the gastric phenotype in multiple GAPPS families. Although penetrance of the gastric polyposis phenotype is high, the phenotype can vary ranging from asymptomatic adults to teenagers presenting with massive symptomatic gastric polyposis, as well as unaffected carriers who had clean endoscopies at ages ranging from 42 to 77 years. However, the penetrance for gastric cancer is less clear. Promoter 1B APC alterations rarely occur in FAP families with gastric fundic gland polyps and colonic polyposis.[70]

###### Duodenum/small bowel tumors

Whereas the incidence of duodenal adenomas is only 0.4% in unselected patients undergoing upper GI endoscopy,[71] duodenal adenomas are found in 80% to 100% of FAP patients. Most are located in the first and second portions of the duodenum, especially in the periampullary region.[50,51,72] In a prospective multicenter surveillance study of duodenal adenomas in 368 participants from northern Europe with FAP, 65% had adenomas at baseline evaluation (mean age, 38 y), with cumulative prevalence reaching 90% by age 70 years. In contrast to earlier beliefs regarding an indolent clinical course, the adenomas increased in size and degree of dysplasia during the 8 years of average surveillance, although only 4.5% developed cancer while under prospective surveillance.[20] This is a large study; however, it is limited by the use of forward-viewing rather than side-viewing endoscopy and the large number of investigators involved in the study. Intestinal polyps can also be assessed in FAP patients using capsule endoscopy.[73-75] One study of computed tomography (CT) duodenography found that larger adenoma size could be accurately measured but smaller, flatter adenomas could not be accurately counted.[76]

Approximately 1.7% of all duodenal cancer cases are attributed to FAP.[17,66 ,77-79] The incidence of duodenal adenocarcinoma in FAP is 4% to 12% lifetime. A retrospective review of FAP patients suggested that the adenoma-carcinoma sequence occurred in a temporal fashion for periampullary adenocarcinomas with a diagnosis of adenoma at a mean age of 39 years, high-grade dysplasia at a mean age of 47 years, and adenocarcinoma at a mean age of 54 years.[80] A decision analysis of 601 FAP patients suggested that the benefit of periodic surveillance starting at age 30 years led to an increased life expectancy of 7 months.[77] Although polyps in the duodenum can be difficult to treat, small series suggest that they can be managed successfully with endoscopy but with potential morbidity—primarily from pancreatitis, bleeding, and duodenal perforation.[81,82]

FAP patients with particularly severe duodenal polyposis, sometimes called dense polyposis, or with histologically advanced duodenal adenomas appear to be at the highest risk of developing duodenal adenocarcinoma.[20,78,83,84] Because the risk of duodenal adenocarcinoma is correlated with the number and size of polyps and the severity of dysplasia of the polyps, a stratification system that incorporates these features was developed to attempt to identify those individuals with FAP at the highest risk of developing duodenal adenocarcinoma.[84] According to this system, known as the Spigelman classification (refer to Table 5), 36% of patients with the most advanced stage will develop carcinoma.[78]

The predictive utility of the Spigelman classification has been called into question. The point system for dysplasia classifies dysplasia as mild, moderate, or severe, yet pathologists do not customarily attempt to distinguish moderate dysplasia from low-grade. There are no studies validating interobserver concordance in classifying a villous component or interpretation of the degree of dysplasia. A study from the Cleveland Clinic comparing Spigelman classification and its components in patients with FAP with and without cancer found neither adenoma count nor villous component to be predictive of cancer risk.[85] While patients with advanced (Spigelman IV) classification were more likely to develop cancer, nearly half of those with cancer did not meet Spigelman IV criteria.

Table 5. Spigelman Classification

Points | Polyp Number | Polyp Size (mm) | Histology | Dysplasia
1 | 1–4 | 1–4 | Tubular | Mild
2 | 5–20 | 5–10 | Tubulovillous | Moderate
3 | >20 | >10 | Villous | Severe

Stage I, 1–4 points; Stage II, 5–6 points; Stage III, 7–8 points; Stage IV, 9–12 points.[84]

###### Other tumors

Other extracolonic tumors arising in FAP patients include papillary thyroid cancer, adrenal tumors, hepatoblastoma, and brain tumors.

Papillary thyroid cancer (cribriform morular type) has been reported to affect 1% to 2% of patients with FAP.[86] However, a study [87] of papillary thyroid cancers in six women with FAP failed to demonstrate loss of heterozygosity (LOH) or pathogenic variants of the wild-type allele in codons 545 and 1061 to 1678 of the six tumors. In addition, four of five of these patients had detectable somatic RET/PTC chimeric genes. This pathogenic variant is generally restricted to sporadic papillary thyroid carcinomas, suggesting the involvement of genetic factors other than APC pathogenic variants. Further studies are needed to show whether other genetic factors such as the RET/PTC chimeric gene are independently responsible for or cooperative with APC variants in causing papillary thyroid cancers in FAP patients.

Adrenal tumors have been reported in FAP patients, and one study demonstrated LOH at the APC locus in an adrenocortical carcinoma (ACC) in an FAP patient.[88] In a study of 162 FAP patients who underwent abdominal CT for evaluation of intra-abdominal desmoid tumors, 15 patients (11 women) were found to have adrenal tumors.[89] Of these, two had symptoms attributable to cortisol hypersecretion. Three of these patients underwent subsequent surgery and were found to have ACC, bilateral nodular hyperplasia, or adrenocortical adenoma. The prevalence of an unexpected adrenal neoplasia in this cohort was 7.4%, which compares with a prevalence of 0.6% to 3.4% (P < .001) in non-FAP patients.[89] No molecular genetic analyses were provided for the tumors resected in this series. A subsequent study identified adrenal lesions in 26% (23 of 90) of patients with FAP, 18% (2 of 11) of patients with AFAP, and 24% (5 of 21) of patients with MAP. Most lesions in this series followed a benign and slowly progressive course; no cases of ACC were reported.[90]

Hepatoblastoma is a rare, rapidly progressive, and usually fatal childhood malignancy that, if confined to the liver, can be cured by radical surgical resection. Multiple cases of hepatoblastoma have been described in children with an APC pathogenic variant.[91-100] Some series have also demonstrated LOH of APC in these tumors.[92,94,101] No specific genotype-phenotype correlations have been identified in FAP patients with hepatoblastoma.[102] (Refer to the Hepatoblastoma section in the PDQ summary on Childhood Liver Cancer Treatment for more information.)

The constellation of CRC and brain tumors has been referred to as Turcot syndrome; however, Turcot syndrome is molecularly heterogeneous. Molecular studies have demonstrated that colon polyposis and medulloblastoma are associated with pathogenic variants in APC (thus representing FAP), while colon cancer and glioblastoma are associated with pathogenic variants in mismatch repair (MMR) genes (thus representing Lynch syndrome).[103]

Medulloblastoma, a highly malignant embryonal central nervous system tumor, accounts for approximately 80% of the brain tumors found in FAP and primarily occurs in children with 70% diagnosed before age 16 years. High-grade astrocytomas and ependymomas have also been described in FAP patients. Although the relative lifetime risk of any brain tumor among members of an FAP family is increased 7-fold and that of medulloblastoma 90-fold, the absolute lifetime risk of any brain tumor is approximately 1% to 2%.[103]

#### Genetics of FAP

##### APC gene

The APC gene on chromosome 5q21 encodes a 2,843-amino acid protein that is important in cell adhesion and signal transduction; the main function of the APC protein is to regulate intracellular concentrations of beta-catenin, a major mediator of the Wnt signal transduction pathway. APC is a tumor suppressor gene, and the loss of APC is among the earliest events in the chromosomal instability colorectal tumor pathway. FAP and AFAP can be diagnosed genetically by testing for germline pathogenic variants in the APC gene in DNA from peripheral blood leukocytes. More than 300 different disease-associated pathogenic variants of the APC gene have been reported.[104] Most of these changes are insertions, deletions, and nonsense variants that lead to frameshifts and/or premature stop codons in the resulting transcript of the gene. The most common APC pathogenic variant (10% of FAP patients) is a deletion of AAAAG in codon 1309; no other pathogenic variants appear to predominate. Variants that reduce rather than eliminate production of the APC protein may also lead to FAP.[105]

##### Genotype-phenotype correlations

Most APC pathogenic variants that occur between codon 169 and codon 1249 result in the classic FAP phenotype.[106-108] There has been much interest in correlating the location of the pathogenic variant within the gene with the clinical phenotype:

- Researchers have found that dense carpeting of colonic polyps, a feature of classic FAP, is seen in most patients with APC pathogenic variants, particularly those variants that occur between codons 1250 and 1464. AFAP is associated with pathogenic variants that occur in or upstream of exon 4 and in the latter two-thirds of exon 15.[106-109] (Refer to the Attenuated Familial Adenomatous Polyposis [AFAP] section of this summary for more information.)
- CHRPE are rarely associated with pathogenic variants that occur before exon 9.[39,108] Individuals with exon 9 variants tend not to have duodenal adenomas.[70,110]
- Families with GAPPS, who express numerous, predominantly fundic gland gastric polyps restricted to the body and fundus with regions of dysplasia or gastric adenocarcinoma, and no evidence of colorectal or duodenal polyposis, were found to possess variants in the promoter (1B) of APC.[70]
- APC pathogenic variants occurring between codons 1445 and 1578 have been associated with an increased incidence of desmoid tumors in FAP patients.[34,37-39]

A low-penetrance APC variant, I1307K, has been studied for its association with CRC. (Refer to the APC I1307K section in the Colorectal Cancer Susceptibility Genes section of this summary for more information.)

##### Genetic testing for FAP

###### Probands

Individuals who present with a classic FAP phenotype are candidates for APC testing. However, in many probands with a personal or family history of polyposis, multigene panel testing is an appropriate option to consider given the genetic heterogeneity of polyposis conditions and the phenotypic overlap among associated syndromes.

In particular, patients who develop fewer than 100 colorectal adenomatous polyps may pose a diagnostic challenge. The differential diagnosis includes AFAP, MAP, polymerase proofreading–associated polyposis (PPAP), and constitutional mismatch repair deficiency (CMMRD).[111] AFAP can be diagnosed by testing for germline APC pathogenic variants. (Refer to the Attenuated Familial Adenomatous Polyposis [AFAP] section of this summary for more information.) MAP is caused by biallelic germline pathogenic variants in the MUTYH gene, inherited in an autosomal recessive manner.[112] PPAP is caused by heterozygous pathogenic variants in POLE and POLD1.[113,114] CMMRD is a condition in which individuals inherit pathogenic variants in both alleles of one MMR gene (MLH1, MSH2, MSH6, PMS2, or EPCAM).[115] For more information, see the MUTYH-Associated Polyposis (MAP), Oligopolyposis, and IHC in constitutional mismatch repair deficiency (CMMRD) syndrome sections.

For example, in a large cross-sectional study, pathogenic variants in APC were found in 80% (95% confidence interval [CI], 71%–87%) of individuals with more than 1,000 adenomas, 56% (95% CI, 54%–59%) in those with 100 to 999 adenomas, 10% (95% CI, 9%–11%) in those with 20 to 99 adenomas, and 5% (95% CI, 4%–7%) in those with 10 to 19 adenomas.[116] In this same study, the prevalence of biallelic MUTYH pathogenic variants was similar to APC for those with the attenuated phenotype (20–99 adenomas), but MUTYH pathogenic variants were also observed in a small minority (2%) of those with classic polyposis.[116]

Most commercial laboratories perform not only full gene sequencing but also deletion/duplication analysis of the APC and other genes. However, it is important to verify the testing methodology with each laboratory. Deletion analysis is especially important for individuals with FAP because 8% to 12% of affected individuals have a whole exon deletion or promoter 1B deletion in the APC gene, which would not be detected with sequencing.[117-120] As mentioned, for patients who present with polyposis, multigene panels that include multiple polyposis genes are often ordered, which simplifies and lowers the cost of testing by assessing all genes at the same time. (Refer to the Multigene [panel] testing section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for more information.)

###### Cascade testing

In families in which a pathogenic variant in the APC gene is identified, predictive testing for at-risk relatives can definitively identify or rule out the variant. Such testing is important to determine whether at-risk relatives need to undergo aggressive screening or whether such procedures are not necessary or can be discontinued (i.e., in relatives who test negative for the familial pathogenic variant).

Most patients with FAP have an affected parent, and a pattern of autosomal dominant inheritance may be observed in the family. Accordingly, cascade genetic counseling and testing may then be extended to at-risk family members. However, it is estimated that 25% of patients with FAP have a de novo pathogenic variant in APC, meaning that the variant does not appear to be inherited from either parent.[121] In cases where the variant cannot be identified in leukocyte DNA of either parent, it is possible that germline mosaicism may explain the finding. Thus, siblings of an individual should always be offered APC testing, but testing aunts, uncles, and cousins of the proband would not be indicated.

The early appearance of FAP clinical features and the subsequent recommendations for surveillance beginning at puberty raise special considerations relating to the genetic testing of minors.[122] Hereditary cancer genetic testing is not recommended for minors unless results will affect medical management in childhood. Thus, FAP presents an example in which possible medical benefit justifies genetic testing of minors in families with a known pathogenic variant, especially for the anticipated 50% of at-risk children who will be found not to be carriers of pathogenic variants and who can thus be spared surveillance. In addition, testing infants for FAP can allow for hepatoblastoma surveillance until age 5 years. Otherwise, if at-risk minors are not tested, high-quality colonoscopy is initiated between ages 10 and 15 years.[123] The psychological impact of such testing is addressed in the Psychosocial Issues in Hereditary Colon Cancer Syndromes section of this summary.

#### Interventions for FAP

##### Colon surveillance

Individuals at risk of FAP, because of a known APC pathogenic variant in either the family or themselves, are evaluated for onset of polyposis by flexible sigmoidoscopy or colonoscopy. Once an FAP family member is found to manifest polyps, the only effective management to prevent CRC is colectomy. Prophylactic surgery has been shown to improve survival in patients with FAP.[124] If feasible, the patient and his/her family members should be included in a registry because it has been shown retrospectively that registration and surveillance reduce CRC incidence and mortality.[125] In patients with classic FAP identified very early in their course, the surgeon, endoscopist, and family may choose to delay surgery for several years in the interest of achieving social milestones. In addition, in carefully selected patients with AFAP (those with minimal polyp burden and advanced age), deferring a decision about colectomy may be reasonable with surgery performed only in the face of advancing polyp burden or dysplasia.

A Finnish nationwide, population-based, retrospective study evaluating whether surveillance of family members with FAP reduced overall mortality and improved survival demonstrated that family members of probands who were recruited to the screening program had equivalent survival to the general population up to 20 years after diagnosis of FAP.[126] The study included 154 families with at least one family member clinically diagnosed with FAP from 1963 to 2015. There were 194 probands and 225 family members (83 diagnosed by genetic testing and 142 by endoscopy) with a median time of follow-up of 11.8 years. In this study, the survival analysis of members of FAP families was calculated using the relative survival estimate.[127] This estimate compares survival among FAP probands and family members with the survival expected in the absence of FAP among individuals of the same gender and age in each calendar year. The relative survival rate was 67% for probands (95% CI, 60%–75%) at 10 years of follow-up and 66% (95% CI, 58%–76%) at 20 years of follow-up. For family members, the relative survival rate was 98% (95% CI, 95%–101%) at 10 years of follow-up and 94% (95% CI, 88%–100%) at 20 years of follow-up. The relative survival rate was 87% (95% CI, 79%–96%) for family members at 25 years of follow-up. The relative survival rate for probands was significantly lower than the relative survival rate for family members (P < .001). The standardized mortality ratio was elevated in probands in both the 0- to 5-year and 5- to 10-year periods of follow-up whereas it remained stable for family members until 20 years of follow-up. This difference was more marked in the beginning of follow-up for probands, considering that most of them were probably symptomatic and most likely had CRC when they were diagnosed with FAP. The authors mentioned that if the CRC was treated successfully without recurrence, the survival of the probands approached that of the family members.

Colonoscopic surveillance usually begins at an early age (10–15 y) in individuals with FAP.[123] (Refer to the Psychosocial Issues in Hereditary Colon Cancer Syndromes section of this summary for more information on the social and emotional implications of early surveillance.) Colonoscopy is the screening tool of choice for individuals with FAP for the following reasons: (a) improved instrumentation for full colonoscopy, (b) sedation, (c) recognition of AFAP, in which the disease typically manifests in the right colon, and (d) the growing tendency to defer surgery for a number of years.[123] The National Comprehensive Cancer Network (NCCN) recommends that individuals who test negative for a known familial APC pathogenic variant undergo average-risk population screening. However, clinical surveillance is warranted in families in which an APC pathogenic variant has not been identified in an affected individual. NCCN also recommends that individuals with an APC pathogenic variant continue colon cancer screening, even if they have not developed colon polyps, since adenomas may not manifest until later in life.[123] (Refer to the PDQ summary on Colorectal Cancer Screening for more information on these methods.)

##### Colorectal surgery

Colon adenomas will develop in nearly 100% of individuals who are APC pathogenic variant positive; risk-reducing surgery comprises the standard of care to prevent CRC after polyps have appeared and are too numerous or histologically advanced to monitor safely using endoscopic resection.

FAP patients and their doctors should have an individualized discussion to decide when surgery will be performed. It is useful to incorporate into the discussion the risk of developing desmoid tumors after surgery, as well as fecundity for women. Timing of risk-reducing surgery usually depends on the number of polyps, their size, histology, and symptomatology.[128] Once numerous polyps have developed, surveillance colonoscopy is no longer useful in timing the colectomy because polyps are so numerous that it is not possible to biopsy or remove all of them. At this time, it is appropriate for patients to consult with a surgeon who is experienced with available options, including total colectomy and restorative proctocolectomy.[129] Rectum-sparing surgery, with sigmoidoscopic surveillance of the remaining rectum, is a reasonable alternative to total colectomy in those compliant individuals with relative rectal sparing of polyps who understand the consequences and make an informed decision to accept the residual risk of rectal cancer occurring despite periodic surveillance.[130]

Surgical options include restorative proctocolectomy with ileal pouch–anal anastomosis (IPAA), total colectomy with ileorectal anastomosis (IRA), or total proctocolectomy with ileostomy (TPC). TPC is reserved for patients with low rectal cancer in which the sphincter cannot be spared or for patients on whom an IPAA cannot be performed because of technical problems. There is no risk of developing rectal cancer after TPC because the whole mucosa at risk is removed. These procedures can be performed using minimally invasive techniques.

Irrespective of whether a colectomy and an IRA or a restorative proctocolectomy is performed, most experts suggest that periodic and lifelong surveillance of the rectum or the ileal pouch be performed to remove or ablate any polyps. In earlier unselected studies, the risk of rectal cancer after total colectomy 20 years after IRA was reported to be as high as 25%.[131,132] This risk has been reported to be much lower with better selection of patients for IRA.[129,133] Factors that have been reported to increase rectal cancer risk after IRA include the number of polyps throughout the colon, the number of polyps in the rectum, the presence of colon cancer at the time of IRA, the length of the rectal stump, the duration of follow-up after IRA, and the genotype.[39,134-136] An abdominal colectomy with IRA as the primary surgery for FAP does not preclude later conversion to an IPAA for uncontrolled rectal polyps and/or rectal cancer. In the Danish Polyposis Registry, the morbidity and functional results of a secondary IPAA (after a previous IRA) in 24 patients were reported to be similar to those of 59 patients who underwent primary IPAA.[137]

In most cases, the clinical polyp burden in the rectum at the time of surgery dictates the type of surgical intervention, namely, restorative proctocolectomy with IPAA versus IRA. Patients with a mild phenotype (<1,000 colonic adenomas) and fewer than 20 rectal polyps may be candidates for IRA at the time of prophylactic surgery.[138] In some cases, however, the polyp burden is equivocal, and in such cases, investigators have considered the role of genotype in predicting subsequent outcomes with respect to the rectum.[139] Several APC pathogenic variants can increase an individual's rectal cancer risk and can therefore increase an individual's risk for eventual completion proctectomy after IRA. These APC pathogenic variants are located in exon 15 in codon 1250, codon 1309, codon 1328, and between codons 1250 and 1464.[140 ,131,141,142] A meta-analysis examined quality of life after restorative proctocolectomy and IPAA in patients with ulcerative colitis and FAP. The results suggested that patients with FAP do marginally better than patients with ulcerative colitis regarding fistula formation, pouchitis, stool frequency, and seepage.[143]

It is important to continue annual surveillance of the ileal pouch in patients who have undergone IPAA because they are at risk of developing neoplasia in the anal transitional zone/residual rectal mucosa and in the ileal pouch. The cumulative risk of developing adenomas in the ileal pouch can be up to 75% for 15 years after surgery has been completed.[144,145] A retrospective study from the Cleveland Clinic Registry followed patients with FAP who underwent IPAA. After a median follow-up period of 10.1 years and a median of four pouchoscopies, 47% of patients (78 of 165) developed rectal mucosa/transitional zone adenomas. Adenomas were more frequently diagnosed in patients who had undergone stapled IPAA (52.3% [72 of 137]) when compared with those who had undergone mucosectomy and handsewn IPAA (21.4% [6 of 28]; P < .005).[146] Although they are rare, carcinomas have been reported in the ileal pouch and anal transition zone after restorative proctocolectomy in patients with FAP.[147] In the Cleveland Clinic study, six patients developed cancer after IPAA (three patients developed cancer while under surveillance, and three patients developed cancer after missing surveillance pouchoscopies).[146]

##### Chemoprevention

Celecoxib, a specific cyclooxygenase 2 (COX-2) inhibitor, and nonspecific COX-2 inhibitors, such as sulindac (a nonsteroidal anti-inflammatory drug [NSAID]), have been associated with a decrease in polyp size and number in FAP patients, suggesting a role for chemopreventive agents in the treatment of this disorder.[148,149] Although celecoxib had been approved by the U.S. Food and Drug Administration (FDA), its license was voluntarily withdrawn by the manufacturer. Currently, there are no FDA-approved drugs for chemoprevention in FAP. Nevertheless, agents such as celecoxib and sulindac are used so commonly that chemopreventive clinical trials typically use one of these agents as a control. A randomized trial showed possible marginal improvement in polyp burden with the combination of celecoxib and eflornithine (i.e., difluoromethylornithine [DFMO]) when compared with celecoxib alone.[150] An international randomized trial analyzed the use of daily sulindac, eflornithine, or sulindac plus eflornithine in 171 individuals with FAP. In the three study arms, there were no significant differences between the frequencies of FAP-related events (i.e., primary end points), which were composites of major surgeries (colectomies/proctocolectomies/pouchectomies/duodenal resections), excisions of advanced adenomas, diagnoses of cancer/high-grade dysplasia, and/or progressions of duodenal polyposis by more than one Spigelman stage.[151] A post-hoc analysis was performed on 158 participants with FAP who were at risk for lower GI neoplasia. Results demonstrated a significant, marked reduction in the likelihood of lower GI tract polyposis progression (hazard ratio [HR], <0.2) in the sulindac plus eflornithine arm versus sulindac alone (HR, 0.195; 95% CI, 0.048–0.803) and versus eflornithine alone (HR, 0.171; 95% CI, 0.042–0.698). Lower GI tract polyposis progression was defined as the need for colectomy, proctocolectomy, proctectomy, pouchectomy, the excision of any polyp that was more than 10 mm, and/or the diagnosis of cancer/high-grade dysplasia. Moreover, 0 of 54 participants randomly assigned to the sulindac plus eflornithine arm required major surgery, versus 7 of 53 (13.2%) in the sulindac-only arm, and 8 of 51 (15.7%) in the eflornithine-only arm (P ≤ .005).[152]

A small, randomized, placebo-controlled, dose-escalation trial of celecoxib in a pediatric population (aged 10–14 y) demonstrated the safety of celecoxib at all dosing levels when administered over a 3-month period.[153] This study found a dose-dependent reduction in adenomatous polyp burden. At a dose of 16 mg/kg/day, which approximates the approved dose of 400 mg twice daily in adults, the reduction in polyp burden paralleled that demonstrated with celecoxib in adults.

Omega-3-polyunsaturated fatty acid eicosapentaenoic acid in the free fatty acid form has been shown to reduce rectal polyp number and size in a small study of patients with FAP after subtotal colectomy.[154] Although not directly compared in a randomized trial, the effect appeared to be similar in magnitude to that previously observed with celecoxib.

It is unclear at present how to incorporate COX-2 inhibitors into the management of FAP patients who have not yet undergone risk-reducing surgery. A double-blind placebo-controlled trial of 41 child and young adult carriers of APC pathogenic variants who had not yet manifested polyposis demonstrated that sulindac may not be effective as a primary treatment in FAP. There were no statistically significant differences between the sulindac and placebo groups over 4 years of treatment in incidence, number, or size of polyps.[149]

Consistent with the effects of COX-2 inhibitors on colonic polyps, in a randomized, prospective, double-blind, placebo-controlled trial, celecoxib reduced, but did not eliminate, the number of duodenal polyps in 32 patients with FAP after a 6-month course of treatment. Of importance, a statistically significant effect was seen only in individuals who had more than 5% of the duodenum involved with polyps at baseline and with an oral dose of 400 mg, given twice daily.[155] A previous randomized study of 24 FAP patients treated with sulindac for 6 months showed a nonsignificant trend in the reduction of duodenal polyps.[156] The same issues surrounding the use of COX-2 inhibitors for the treatment of colonic polyps apply to their use for the treatment of duodenal polyps (e.g., only partial elimination of the polyps, complications secondary to the COX-2 inhibitors, and loss of effect after the medication is discontinued).[155]

Because of the common clustering of adenomatous polyps around the duodenal papilla (where bile enters the intestine) and preclinical data suggesting that ursodeoxycholate inhibits intestinal adenomas in mice that harbor an Apc germline variant,[157] two trials that employ ursodeoxycholate have been performed.[158,159] In both studies, ursodeoxycholate did not have a significant chemopreventive effect on duodenal polyps; paradoxically, in one study, ursodeoxycholate in combination with celecoxib appeared to promote polyp density in patients with FAP.

Because of reports demonstrating an increase in cardiac-related events in patients taking rofecoxib and celecoxib,[160-162] it is unclear whether this class of agents will be safe for long-term use for patients with FAP and in the general population. Also, because of the short-term (6 months) nature of these trials, there is currently no clinical information about cardiac events in FAP patients taking COX-2 inhibitors on a long-term basis.

Level of evidence (celecoxib): 1b

One cohort study has demonstrated regression of colonic and rectal adenomas with sulindac treatment in FAP. The reported outcome of this trial was the number and size of polyps, a surrogate for the clinical outcome of main interest, CRC incidence.[163]

Level of evidence (sulindac): 1b

Preclinical studies of a small-molecule epidermal growth factor receptor (EGFR) inhibitor and low-dose sulindac in the Apc^min/+^ mouse diminished intestinal adenoma development by 87% [164] suggesting that EGFR inhibitors had the potential to inhibit duodenal polyps in FAP patients. A 6-month double-blind, randomized, placebo-controlled trial tested the efficacy of sulindac, 150 mg twice daily, and erlotinib, 75 mg daily, versus placebo in FAP or AFAP patients with duodenal polyps.[165] Ninety-two patients with FAP or AFAP were randomly assigned to receive study drugs or placebo and underwent pretreatment and posttreatment upper endoscopies to determine the changes in the sum diameter of the polyps and number of polyps in a 10 cm segment of proximal duodenum. The trial was terminated prematurely because the primary endpoint was met. The intent-to-treat analysis demonstrated a median decrease in duodenal polyp burden (sum of diameters) of 8.5 mm in the sulindac/erlotinib arm while there was an 8 mm increase in the placebo arm (P < .001). Significantly higher rates of grade 1 and grade 2 adverse events occurred in the treatment arm than in the placebo arm: in the treatment arm, 60.9% developed an acneiform rash and 32.6% developed oral mucositis; in the placebo arm, 19.6% developed an acneiform rash and 10.9% developed oral mucositis. A 2018 trial in 82 individuals with FAP found that combination treatment with sulindac (150 mg twice daily) and erlotinib (75 mg daily) compared with placebo resulted in a significantly lower (69.4%) colorectal polyp burden after 6 months of treatment (95% CI, 28.8%–109.2%; P = .009).[166] There was a reduction in polyp burden in both those with an entire colorectum and those with only a rectal pouch or rectum. However, it is unclear to what extent erlotinib contributed to this reduction given that sulindac has been proven effective in the lower GI tract.

On the basis of the previously modest effects of sulindac and celecoxib on duodenal polyps in patients with FAP [149,163] and the dramatic effect of genetic EGFR inhibition on intestinal adenoma development in the Apc^min/+^ mouse,[167] it is likely that erlotinib was responsible for the success of these trials. An ongoing clinical trial (NCT02961374 (https://www.cancer.gov/clinicaltrials/NCT02961374)) is determining whether lower doses of erlotinib alone are sufficient for significantly reducing duodenal polyp burden in patients with FAP and AFAP.

Level of evidence (sulindac + erlotinib): 1b

##### Management of extracolonic tumors

Patients who carry APC germline pathogenic variants are at increased risk of other types of malignancies, including desmoid tumors, gastric tumors, duodenal cancer, small bowel cancer, hepatoblastoma, thyroid cancer, and brain tumors. The management of these extracolonic tumors is described below.

###### Desmoid tumors

The management of desmoids in FAP can be challenging and can complicate prevention efforts. There is no accepted standard treatment for desmoid tumors. Multiple medical treatments have generally been unsuccessful in the management of desmoids. Treatments have included antiestrogens, NSAIDs, chemotherapy, and radiation therapy, among others. Studies have evaluated the use of raloxifene alone, tamoxifen or raloxifene combined with sulindac, and pirfenidone alone.[168-170]

Thirteen patients with intra-abdominal desmoids and/or unfavorable response to other medical treatments who had expression of estrogen-alpha receptors in their desmoid tissues were included in a prospective study of raloxifene, given in doses of 120 mg daily.[168] Six patients had been on tamoxifen or sulindac before treatment with raloxifene, and seven patients were previously untreated. All 13 patients with intra-abdominal desmoid disease had either a partial or a complete response 7 months to 35 months after starting treatment, and most desmoids decreased in size at 4.7 months (± 1.8 mo) after treatment. Response occurred in patients with desmoid plaques and with distinct lesions. Study limitations include small sample size and the clinical evaluation of response, which was not consistent in all patients. Several questions remain concerning the outcomes of patients with desmoid tumors not expressing estrogen-alpha receptors who have received raloxifene, as well as which patients may benefit from this potential treatment.

A second study of 13 patients with FAP-associated desmoid tumors, who were treated with tamoxifen 120 mg/day or raloxifene 120 mg/day in combination with sulindac 300 mg/day, reported that ten patients had either stable disease (n = 6) or a partial or complete response (n = 4) for more than 6 months and that three patients had stable disease for more than 30 months.[169] These results suggest that the combination of these agents may be effective in slowing the growth of desmoid tumors. However, the natural history of desmoids is variable, with both spontaneous regression and variable growth rates.

A third study reported mixed results in 14 patients with FAP-associated desmoid tumors treated with pirfenidone for 2 years.[170] In this study, some patients had disease regression, some patients had disease progression, and some patients had stable disease.

There are reports of using imatinib mesylate to treat desmoid tumors in FAP patients with some success.[171,172] Nilotinib demonstrated potential to stabilize desmoid tumor growth after treatment failure with imatinib in patients with desmoid tumors.[173]

Level of evidence: 4

The benefit of the tyrosine kinase inhibitor sorafenib in the treatment of desmoid tumors was demonstrated in a phase III randomized trial comparing sorafenib (400 mg daily) with placebo in 87 patients with unresectable progressive or symptomatic desmoid tumors.[174] Crossover to the sorafenib group was permitted for patients in the placebo group who had disease progression on the placebo arm of the study. Objective responses were demonstrated in 16 of 49 patients treated with sorafenib (33%) compared with 7 of 35 placebo-treated patients (20%). Additionally, the 2-year progression-free survival (PFS) rate was significantly higher for sorafenib (81%) than placebo (36%); the HR for progression or death was 0.13 (95% CI, 0.05–0.31; P < .001). The most frequently reported adverse events were grade 1 or grade 2 rash (73%), fatigue (67%), hypertension (55%), and diarrhea (51%). Despite a relatively favorable toxicity profile, approximately 20% of patients discontinued sorafenib due to toxicity, emphasizing the importance of appropriate dose delays and interruptions for the treatment of adverse events.

Level of evidence: 1

Because of the high rates of morbidity and recurrence, in general, surgical resection is not recommended in the treatment of intra-abdominal desmoid tumors. A review of experiences at one hospital suggested that surgical outcomes with intra-abdominal desmoid tumors may be better than previously believed.[175,176] Issues of subject selection are critical in evaluating surgical outcome data.[175] Abdominal wall desmoid tumors can be treated with surgical resection, but the recurrence rate is high.

###### Stomach tumors

It is not clear how to manage gastric adenomas. Only retrospective case series are available and point to a relatively low prevalence of gastric adenocarcinoma development in FAP patients.[177,178] More recently, a rise in incidence of gastric adenocarcinoma was observed in a Western FAP database [69] suggesting that a possible change in the management of gastric tumorigenesis in FAP may be in order. One group recommends endoscopic polypectomy for the management of gastric adenomas.[69] The management of adenomas in the stomach is usually individualized based on the size of the adenoma and the degree of dysplasia.

Level of evidence: 5

###### Duodenum/small bowel tumors

Endoscopic surveillance usually begins between ages 20 to 25 years in patients with FAP. Baseline upper endoscopy may be performed at an earlier age if the patient has a family history of large duodenal adenoma burden or duodenal/ampullary cancer.[67] The subsequent intervals between endoscopy vary according to the findings of the previous endoscopy, often based on Spigelman stage. Recommended intervals are based on expert opinion although the relatively liberal intervals for stage 0 to stage II disease are based in part on the natural history data generated by the Dutch/Scandinavian duodenal surveillance trial (refer to Table 6 for available recommendations regarding screening frequency by Spigelman stage).[20]

The main advantages of the Spigelman classification are its long-standing familiarity to and usage by those in the field, which allows reasonable standardization of outcome comparisons across studies.[63,179] However, the following are limitations of application of the Spigelman classification:

- Most pathologists do not employ the term moderate dysplasia, preferring a simpler low- versus high-grade dysplasia system.
- Because of the villous nature of normal duodenal epithelium, pathologists commonly disagree over the classification of tubular, tubulovillous, and villous.
- Spigelman staging requires biopsy, which is not always essential when only a few small plaques are present; conversely, for larger adenomas, sampling variation leads to understaging.[180,181]

Table 6. Recommended Screening Intervals and Interventions by Spigelman Stage

Spigelman Stage | NCCN (2024) [123] | ESMO (2013) [182]
0 (no polyps) | Endoscopy every 3–5 y | Not specified
I | Endoscopy every 2–3 y | Endoscopy every 5 y
II | Endoscopy every 1–2 y | Endoscopy every 3 y
III | Endoscopy every 6–12 mo | Endoscopy every 1–2 y
IV | Expert endoscopic surveillance every 3–6 mo | Endoscopy every 6-12 mo
IV | Excision/ablation of resectable large or villous adenomatous polyps and endoscopic ampullectomy are options that may help individuals avoid surgery | Endoscopy every 6-12 mo
IV | Surgical evaluation and counseling for individuals with high-grade dysplasia, invasive carcinoma, or dense polyposis that cannot be removed endoscopically | Surgical options include duodenotomy with polypectomy, pancreas-sparing duodenectomy and pancreaticoduodenectomy (Whipple procedure)

ESMO = European Society of Medical Oncology; NCCN = National Comprehensive Cancer Network.

See below for additional information about the use of surgical resection in Spigelman stage IV disease.

The results of long-term duodenal adenoma surveillance of FAP patients in Nordic countries and the Netherlands revealed significant duodenal cancer risk in FAP patients.[183] According to the protocol, biennial frontal-viewing endoscopy was performed from 1990 through 2000. Subsequently, patients were followed up with surveillance according to international guidelines. The study group comprised 261 of 304 patients (86%) who had more than one endoscopy. Median follow-up was 14 years (range, 9–17 y). The lifetime risk of duodenal adenomatosis was 88%. Forty-four percent of patients had worsening Spigelman stage over time, whereas 12% improved and 34% remained unchanged. Twenty patients (7%) developed duodenal cancer at a median age of 56 years (range, 44–82 y). The cumulative cancer incidence was 18% at age 75 years (95% CI, 8%–28%). Survival in patients with symptomatic cancers was worse than those diagnosed at surveillance endoscopy.

Level of evidence (screening for duodenum/small bowel tumors): 3

Many factors, including severity of polyposis, comorbidities, patient preferences, and availability of adequately trained physicians, determine whether surgical or endoscopic therapy is selected for polyp management. Endoscopic resection or ablation of large or histologically advanced adenomas appears to be safe and effective in reducing the short-term risk of developing duodenal adenocarcinoma;[81,82,184] however, patients managed with endoscopic resection of adenomas remain at substantial risk of developing recurrent adenomas in the duodenum.[180] The most definitive procedure for reducing the risk of adenocarcinoma is surgical resection of the ampulla and duodenum, although these procedures also have higher morbidity and mortality associated with them than do endoscopic treatments. Duodenotomy and local resection of duodenal polyps or mucosectomy have been reported, but invariably, the polyps recur after these procedures.[185] In a series of 47 patients with FAP and Spigelman stage III or stage IV disease who underwent definitive radical surgery, the local recurrence rate was reported to be 9% after a mean follow-up period of 44 months. This local recurrence rate was dramatically lower than any local endoscopic or surgical approach from the same study.[180] Pancreaticoduodenectomy and pancreas-sparing duodenectomy are appropriate surgical therapies that are believed to substantially reduce the risk of developing periampullary adenocarcinoma.[181,185-187] If such surgical options are considered, preservation of the pylorus will benefit this patient group because most will have undergone a subtotal colectomy with IRA or total colectomy with IPAA. A matched case-control study of 32 people with FAP (all patients had pancreaticoduodenectomy after IPAA) found that pancreaticoduodenectomy did not impact quality of life.[188] As noted in a Northern European study,[20] and others,[189,190] most patients with duodenal adenomas will not develop cancer and can be followed with endoscopy. However, individuals with advanced adenomas (Spigelman stage III or stage IV disease) generally require endoscopic or surgical treatment of the polyps. Chemoprevention studies for duodenal adenomas in FAP patients are under way and may offer an alternate strategy in the future. (Refer to the Chemoprevention section of this summary for more information.)

The endoscopic approach to larger and/or flatter adenomas of the duodenum depends on whether the ampulla is involved. Endoscopic mucosal resection (EMR) after submucosal injection of saline, with or without epinephrine and/or dye, such as indigo carmine, can be employed for nonampullary lesions. Ampullary lesions require even greater care including endoscopic ultrasound evaluation for evidence of bile or pancreatic duct involvement. Stenting of the pancreatic duct is commonly performed to prevent stricturing and pancreatitis. The stents require endoscopic removal at an interval of 1 to 4 weeks. Because the ampulla is tethered at the ductal orifices, it typically does not uniformly lift with injection, so injection is commonly not used. Any consideration of EMR or ampullectomy requires great experience and judgment, with careful consideration of the natural history of untreated lesions and an appreciation of the high rate of adenoma recurrence despite aggressive endoscopic intervention.[82,180,181,186,191-194] The literature uniformly supports duodenectomy for Spigelman stage IV disease. For Spigelman stage II and stage III disease, there is a role for endoscopic treatment invariably focusing on the one or two worst lesions that are present.

Reluctance to consider surgical resection is related to the short-term morbidity and mortality and the long-term complications related to surgery. Although these concerns are likely overstated,[180,181,187,191,195-201] fear of surgical intervention can lead to aggressive and somewhat ill-advised endoscopic interventions. In some circumstances, endoscopic resection of ampullary and/or other duodenal adenomas cannot be accomplished completely or safely by endoscopic means, and duodenectomy cannot be accomplished without risking a short-gut syndrome or cannot be done at all because of mesenteric fibrosis. In such cases, surgical transduodenal ampullectomy/polypectomy can be performed. However, this is associated with a high risk of local recurrence similar to that of endoscopic treatment.

Level of evidence (treatment of duodenum/small bowel tumors): 4

###### Other tumors

Although level 1 evidence is lacking for the following surveillance methods, they are based on expert opinion. NCCN recommends baseline thyroid ultrasound beginning in the late teenage years to screen for papillary thyroid cancer in patients with FAP, with a repeat ultrasound every 2 to 5 years if results are normal. When individuals have a family history of thyroid cancer, shorter screening intervals can be used.[123,202,203]

Level of evidence (thyroid cancer ultrasound screening): 4

Although level 1 evidence is lacking for the following surveillance methods, they are based on expert opinion. NCCN has suggested that the following be considered for children with a predisposition to FAP: liver palpation, abdominal ultrasound, and measurement of serum alpha-fetoprotein every 3 to 6 months for the first 5 years of life.[123,204] It is not necessary to continue screening after age 5 years.

Level of evidence (hepatoblastoma or adrenal cancer screening): 5

Although level 1 evidence is lacking for the following surveillance methods, they are based on expert opinion. Medulloblastoma is a highly malignant tumor that is usually only symptomatic 6 months or less before diagnosis; annual surveillance of asymptomatic patients may be insufficient. Thus, surveillance by means of regular CT or magnetic resonance imaging (MRI) cannot be advocated. FAP family members who do not yet have polyposis but have signs or symptoms suggestive of a brain tumor should be evaluated with neuroimaging because brain tumors present before polyposis in more than half of FAP patients. Careful evaluation is also important among FAP families in which one member already has a brain tumor because familial clustering occurs. Of such families with FAP-associated brain tumors, 40% had two affected members.[103]

### Attenuated Familial Adenomatous Polyposis (AFAP)

#### Clinical phenotype

AFAP was first described clinically in 1990 in a large kindred with a variable number of adenomas. The average number of adenomas in this kindred was 30, although they ranged in number from a few to hundreds.[205] It has been recommended that the management of AFAP patients include colonoscopy rather than flexible sigmoidoscopy because the adenomas can be predominantly right-sided.[206] Adenomas in AFAP are believed to form around the age of mid-twenties to late twenties.[57] Similar to classic FAP, the risk of CRC is higher in individuals with AFAP; the average age at diagnosis, however, is older than classic FAP at 56 years.[106,107,207] Affected family members have developed CRCs with very few synchronous polyps.[2] Extracolonic manifestations similar to those in classic FAP also occur in AFAP. These manifestations include upper GI polyps (FGPs, duodenal adenomas, and duodenal adenocarcinoma), osteomas, epidermoid cysts, and desmoid tumors.[57] Because of the specific sites of APC pathogenic variants causing AFAP, these patients typically lack CHRPE lesions.

#### Genetics of AFAP

AFAP is associated with particular subsets of APC pathogenic variants. Three groups of site-specific APC pathogenic variants causing AFAP have been characterized:[106-109 ,208,209]

- Pathogenic variants associated with the 5’ end of APC and exon 4 in which patients can manifest 2 to more than 500 adenomas, including the classic FAP phenotype and upper GI polyps. Any pathogenic variant in the first four exons,[106] as there is an internal ribosomal entry site in exon 4 that permits the ribosome to skip premature truncation pathogenic variants.[210]
- Exon 9–associated phenotypes in which patients may have 1 to 150 adenomas but no upper GI manifestations.
- 3’ region pathogenic variants in which patients have very few adenomas (<50).

In the absence of family history of similarly affected relatives, the differential diagnosis may include AFAP (including MAP), Lynch syndrome, CMMRD, germline variants in the DNA polymerase proofreading subunits (POLD1 or POLE), or an otherwise unclassified sporadic or genetic problem. A careful family history may implicate AFAP or Lynch syndrome.

APC testing is an important component of the evaluation of patients suspected of having AFAP.[206] If germline APC pathogenic variant testing is negative in suspected AFAP individuals, genetic testing for MUTYH, POLE, and POLD1 pathogenic variants may be warranted.[117]

#### Clinical management

Patients found to have an unusually or unacceptably high adenoma count at an age-appropriate colonoscopy pose a differential diagnostic challenge.[211 ,212] The role for and timing of risk-reducing colectomy in AFAP is controversial.[213]

Table 7 summarizes the clinical practice guidelines from different professional societies regarding surveillance of AFAP.

Table 7. Clinical Practice Guidelines for Colon Surveillance of Attenuated Familial Adenomatous Polyposis (AFAP)

Organization | Condition | Screening Method | Screening Frequency | Age Screening Initiated | Comment
Europe Mallorca Group (2008) [214] | AFAP | Colonoscopy | Every 2 y; every 1 y if adenomas are detected | 18–20 y
NCCN (2024) [123] | Personal history of AFAP with small adenoma burden^a^ | High-quality colonoscopy and polypectomy | Every 1–2 y | | If patient had colectomy with IRA, endoscopic evaluation every 6–12 mo, depending on the patient's polyp burden
NCCN (2024) [123] | Personal history of AFAP with small adenoma burden^a^ | High-quality colonoscopy and polypectomy | Every 1–2 y | | Chemoprevention may be considered in patients with progressive polyp burdens to manage the remaining rectum or pouch postcolectomy; at this time, the FDA has not approved medications for this specific indication; NCCN recommends that patients seek the advice of providers with expertise in FAP/AFAP
NCCN (2024) [123] | Personal history of AFAP with adenoma burden that cannot be handled endoscopically | Not applicable | Not applicable | Not applicable | Colectomy with IRA preferred. Consider proctocolectomy with IPAA if patient has dense rectal polyposis
NCCN (2024) [123] | Asymptomatic at-risk family member; familial pathogenic variant known; APC pathogenic variant status positive | High-quality colonoscopy | Every 1–2 y if APC positive | Late teens | If adenomas are found, follow AFAP screening guidelines
NCCN (2024) [123] | Asymptomatic at-risk family member; familial pathogenic variant known; APC pathogenic variant status unknown | High-quality colonoscopy | If genetic testing is not performed, colonoscopy can be done every 2 y; if adenomas are found, follow AFAP screening guidelines; if adenomas are not found on multiple subsequent exams, a prolonged screening interval (>2 y) may be considered | Late teens | Discuss benefits of genetic testing

FDA = U.S. Food and Drug Administration; IPAA = ileal pouch–anal anastomosis; IRA = ileorectal anastomosis; NCCN = National Comprehensive Cancer Network.

^a^Colonoscopy with polypectomy can adequately remove polyps when individuals have a small adenoma burden, which is defined as fewer than 20 adenomas that do not have advanced histology and are each <1 cm in diameter.

### MUTYH-Associated Polyposis (MAP)

MAP is an autosomal recessively inherited polyposis syndrome caused by pathogenic variants in the Mut Y homolog gene. The Mut Y homolog gene, which is known as MUTYH, was initially called MYH, but was subsequently corrected because the myosin heavy chain gene already had that designation. MUTYH is located on chromosome 1p34.3-32.1.[215] The protein encoded by MUTYH is a base excision repair glycosylase, which repairs one of the most common forms of oxidative damage. Over one hundred unique sequence variants of MUTYH have been reported. A founder pathogenic variant with ethnic differentiation is assumed for MUTYH pathogenic variants. In White populations of northern European descent, two major variants, Y179C and G396D (formerly known as Y165C and G382D), account for 70% of biallelic pathogenic variants in MAP patients; 90% of these patients carry at least one of these pathogenic variants.[216] Other causative variants that have been found include P405L (formerly known as P391L) (Netherlands),[217,218] E480X (India),[219] Y104X (Pakistan),[220] 1395delGGA (Italy),[221,222] 1186-1187insGG (Portugal),[223] and p.A359V (Japan and Korea).[224 -226]

The MUTYH gene was first linked to polyposis in 2002 in three siblings with multiple colonic adenomas and CRC but no APC pathogenic variant.[112] MAP has a broad clinical spectrum. Most often it resembles the clinical picture of AFAP, but it has been reported in individuals with phenotypic resemblance to classical FAP and Lynch syndrome.[227] MAP patients tend to develop fewer adenomas at a later age than patients with APC pathogenic variants [228,229] but still carry a high risk of CRC (35%–75%).[7,230,231] A 2012 study of colorectal adenoma burden in 7,225 individuals reported a prevalence of biallelic MUTYH pathogenic variants of 4% (95% CI, 3%–5%) among those with 10 to 19 adenomas, 7% (95% CI, 6%–8%) among those with 20 to 99 adenomas, and 7% (95% CI, 6%–8%) among those with 100 to 999 adenomas.[116] This broad clinical presentation results from the MUTYH gene's ability to cause disease in its homozygous or compound heterozygous forms. Based on studies from multiple FAP registries, approximately 7% to 19% of patients with an FAP phenotype and without a detectable APC germline pathogenic variant carry biallelic variants in the MUTYH gene.[7,219,229,232]

Adenomas, serrated adenomas, and hyperplastic polyps can be seen in MAP patients.[233] The CRCs tend to be right-sided and synchronous at presentation and seem to carry a better prognosis than sporadic CRC.[215] Clinical management guidelines for MAP recommend screening with high-quality colonoscopy and polypectomy every 1 to 2 years if fewer than 20 adenomas are found. Colonoscopy begins no later than age 25 to 30 years (although screening at a younger age may be considered based on family history).[123,214,230] Upper endoscopic surveillance begins at age 30 to 35 years.[214] (Refer to Table 8 for more information about available clinical practice guidelines for colon surveillance in MAP patients.) The recommended upper endoscopic surveillance interval can be based on the burden of involvement according to Spigelman criteria.[214] Total colectomy with ileorectal anastomosis or subtotal colectomy may be necessary for patients with MAP depending on overall polyp burden.[230,234]

Although MAP is the only known biallelic (recessive) adenoma cancer predisposition syndrome described to date, there are examples of biallelic cases presenting with childhood tumors in which MMR genes are involved. For more information, see the IHC in constitutional mismatch repair deficiency (CMMRD) syndrome section.

Table 8 summarizes the clinical practice guidelines from different professional societies regarding colon surveillance of biallelic MAP.

Table 8. Clinical Practice Guidelines for Colon Surveillance of MUTYH-Associated Polyposis (MAP)

Organization | Condition | Screening Method | Screening Frequency | Age Screening Initiated | Comment
Nieuwenhuis et al. (2012) [230] | One MUTYH pathogenic variant (monoallelic/MUTYH heterozygote) | Colonoscopy | Every 1–2 y
NCCN (2024) [123] | Biallelic MUTYH pathogenic variants; personal history of MAP, small adenoma burden^a^ | High-quality colonoscopy and polypectomy | Every 1–2 y | No later than age 25 to 30 y | If patient had colectomy with IRA, endoscopic evaluation every 6–12 mo, depending on the patient's polyp burden
NCCN (2024) [123] | Biallelic MUTYH pathogenic variants; personal history of MAP, small adenoma burden^a^ | High-quality colonoscopy and polypectomy | Every 1–2 y | No later than age 25 to 30 y | Chemoprevention may be considered in certain individuals (especially those with a high polyp burden postcolectomy), but data are limited in patients with MAP; consider referring patients to a center that has experience with MAP to discuss chemoprevention and surgery options
NCCN (2024) [123] | Biallelic MUTYH pathogenic variants; personal history of MAP with adenoma burden that cannot be managed endoscopically | Not applicable | Not applicable | Not applicable | Colectomy with IRA. Consider proctocolectomy with IPAA if patient has dense rectal polyposis. If patient had colectomy with IRA, endoscopic evaluation of the rectum may be done every 6–12 mo based on polyp burden
NCCN (2024) [123] | Asymptomatic, at-risk family member; familial pathogenic variant known; MUTYH pathogenic variant status unknown | High-quality colonoscopy | Every 1–2 y | No later than age 25–30 y | Repeat screening every 1–2 years if polyps are not found; the screening interval can be lengthened if an individual does not have polyps on multiple subsequent colonoscopies, based on a provider's judgment; if polyps are found, use MAP screening guidelines. Discuss benefits of genetic testing if the patient's pathogenic variant status is unknown
NCCN (2024) [123] | Asymptomatic, at-risk family member; familial pathogenic variant known; no MUTYH pathogenic variant found | General population screening
NCCN (2024) [123] | One MUTYH pathogenic variant (monoallelic/MUTYH heterozygote); proband has a personal history or an FDR with CRC/colon polyps | Increased frequency of screening based on the patient's personal or family history of CRC/colon polyps (refer to NCCN guidelines for CRC screening) [235]
NCCN (2024) [123] | One MUTYH pathogenic variant (monoallelic/MUTYH heterozygote); proband does not have a personal history or an FDR with CRC/colon polyps | General population screening

CRC = colorectal cancer; FDR = first-degree relative; IPAA = ileal pouch–anal anastomosis; IRA = ileorectal anastomosis; NCCN = National Comprehensive Cancer Network.

^a^Colonoscopy with polypectomy can adequately remove polyps when individuals have a small adenoma burden, which is defined as fewer than 20 adenomas that do not have advanced histology and are each <1 cm in diameter.

Many extracolonic cancers have been reported in patients with MAP including gastric, small intestinal, endometrial, liver, ovarian, bladder, thyroid, and skin cancers (melanoma, squamous epithelial, and basal cell carcinomas).[236,237] Additionally, noncancerous extracolonic manifestations have been reported in a few MAP patients including lipomas, congenital hypertrophy of the retinal pigment epithelium, osteomas, and desmoid tumors.[221,229,237,238] Female MAP patients have an increased risk of breast cancer.[239] These extracolonic manifestations seem to occur less frequently in MAP than in FAP, AFAP, or Lynch syndrome.[240,241]

#### Duodenal polyps in MAP

Similar to FAP, individuals with MAP often develop duodenal adenomas, and are at risk of developing duodenal cancer. Given the relatively recent identification of MAP compared with FAP, the incidence of duodenal polyps and risk of duodenal cancer in MAP is less well defined. Small case series have suggested the incidence of duodenal polyps in MAP to be approximately 30%, considerably lower than that of FAP. In a registry-based study the prevalence of duodenal polyps was 17%; however, only 50% of individuals in this study had undergone an upper GI endoscopy, suggesting the incidence of duodenal polyps was likely underestimated. The lifetime risk of duodenal cancer was estimated to be 4%.[237]

A registry study from the United Kingdom and the Netherlands explored incidence of duodenal polyps and duodenal cancer in a group of patients with MAP who were undergoing regular duodenal surveillance.[242] Of 92 patients, 31 (34%) had evidence of duodenal polyps. The median age at duodenal adenoma detection was 50 years, and in 65% of patients, duodenal adenomas were diagnosed at baseline endoscopy. Eighty-four percent of patients had Spiegelman stage I or stage II polyposis at first detection of polyps, with no patients with stage IV polyposis and no high-grade dysplasia detected. In subsequent surveillance only two patients progressed to Spiegelman stage IV polyposis, after 3.6 and 7.0 years, respectively. There additionally appeared to be sparing of the ampulla, with only two individuals having diminutive polyps without dysplasia in the ampulla. No cancers were detected in patients enrolled in upper GI surveillance programs within these registries. Two individuals with MAP were diagnosed with ampullary and duodenal cancer respectively at ages 83 and 63 years at the time of first-ever upper GI endoscopies. Therefore, duodenal polyps appear less frequently in MAP when compared with FAP; duodenal polyps also appear at a later age in MAP. Based on these results, the authors suggest upper GI endoscopic screening in MAP be initiated at age 35 years.

Because MAP has an autosomal recessive inheritance pattern, siblings of an affected patient have a 25% chance of also carrying biallelic MUTYH pathogenic variants and should be offered genetic testing. Similarly, testing can be offered to the partner of an affected patient so that the risk in their children can be assessed.

The clinical phenotype of monoallelic MUTYH pathogenic variants is less well characterized with respect to incidence and associated clinical phenotypes, and its role in susceptibility to polyposis and colorectal carcinoma remains unclear. Approximately 1% to 2% of the general population carry a pathogenic variant in MUTYH.[7,112,229] A 2011 meta-analysis found that carriers of monoallelic MUTYH pathogenic variants are at modestly increased risk of CRC (odds ratio [OR], 1.15; 95% CI, 0.98–1.36); however, given the rarity of carriers of monoallelic pathogenic variants, they account for only a trivial proportion of all CRC cases.[243] A large study of 2,332 heterozygotes among 9,504 relatives of 264 CRC cases with a MUTYH pathogenic variant found that the risk of CRC at age 70 years was 7.2% for men and 5.6% for women, irrespective of family history. Among those with an FDR with a CRC diagnosis before age 50 years, the risk at age 70 years was 12.5% for men and 10% for women.[231] Caution should be exercised in the interpretation of this study as the vast majority of carrier status from this study was imputed and not based on genotype. The authors felt the risk for MUTYH heterozygotes with an FDR with CRC was sufficiently high to warrant more intensive surveillance than the general population (but the same as for anyone with an FDR with CRC diagnosed before age 50 y).[228,231]

MMR genes may interact with MUTYH and increase the risk of CRC. An association between MUTYH and MSH6 has been reported. Both proteins interact together in base excision repair processes. A study reported a significant increase of MSH6 pathogenic variants in carriers of monoallelic MUTYH pathogenic variants with CRC compared with noncarriers with CRC (11.5% vs. 0%; P = .037).[244] However, a German study failed to duplicate these findings.[245] Additionally, a larger study found no increased cancer risk for carriers of MMR pathogenic variants with a MUTYH variant compared with those with a MMR pathogenic variant alone.[246]

### Lynch Syndrome

#### Introduction

Lynch syndrome is the most common inherited CRC syndrome and accounts for approximately 3% of all newly diagnosed cases of CRC. It is an autosomal dominant condition caused by pathogenic variants in the MMR genes MLH1 (mutL homolog 1), MSH2 (mutS homolog 2), MSH6 (mutS homolog 6), and PMS2 (postmeiotic segregation 2), as well as the gene EPCAM (epithelial cellular adhesion molecule, formerly known as TACSTD1), in which deletions in EPCAM cause epigenetic silencing of MSH2. Lynch syndrome is also associated with a predisposition for developing several extracolonic manifestations, including sebaceous adenomas and cancers of the endometrium and ovaries, stomach, small intestine, transitional cell carcinoma of the ureters and renal pelvis, hepatobiliary system, pancreas, and brain. Lynch syndrome–associated cancers exhibit MSI; therefore, tumor testing is a key component in the diagnosis of Lynch syndrome, in addition to family history. Universal tumor testing of all CRCs is now recommended as a strategy to screen for Lynch syndrome and identify those individuals who may subsequently benefit from germline genetic testing. Intensive cancer screening and surveillance strategies, including frequent colonoscopy, along with risk-reducing surgeries, are mainstays in patients with Lynch syndrome.

##### History of Lynch syndrome

Between 1913 and 1993, numerous case reports of families with apparent increases in CRC were reported. As series of such reports accumulated, certain characteristic clinical features emerged: early age at onset of CRC; high risk of synchronous (and metachronous) colorectal tumors; preferential involvement of the right colon; improved clinical outcome; and a range of associated extracolonic sites including the endometrium, ovaries, other sites in the GI tract, uroepithelium, brain, and skin (sebaceous tumors). Terms such as cancer family syndrome and hereditary nonpolyposis colorectal cancer (HNPCC) were used to describe this entity.[247]

The term Lynch syndrome replaced HNPCC and is applied to cases in which the genetic basis can be confidently linked to a germline pathogenic variant in a DNA MMR gene. Moreover, HNPCC is misleading as many patients have polyps and many have tumors other than CRC.

With the increased recognition of families that were considered to have a genetic predisposition to the development of CRC, research for a causative etiology led to the development of the Amsterdam criteria in 1990.[248] The Amsterdam criteria were originally used for the identification of high-risk families and included fulfillment of all of the following: three or more cases of CRC over two or more generations, with at least one diagnosed before age 50 years, and no evidence of FAP.

In 1987, a chromosomal deletion of a small segment of 5q led to the detection of a genetic linkage between FAP and this genomic region,[249] from which the APC gene was eventually cloned in 1991.[250] This led to searches for similar linkage in families suspected of having Lynch syndrome who had multiple cases of CRC inherited in an autosomal dominant fashion and young onset of cancer development. The APC gene was one of several genes (along with DCC and MCC) evaluated in families that fulfilled Amsterdam criteria, but no linkage was found among the Lynch kindreds. In 1993, an extended genome-wide search resulted in the recognition of a candidate chromosome 2 susceptibility locus in large families. Once MSH2, the first Lynch syndrome–associated gene, was sequenced, it was evident from the somatic variant patterns in the CRC tumors that the MMR family of genes was likely involved. Additional MMR genes were subsequently linked to Lynch syndrome, including MLH1, MSH6, and PMS2. Lynch syndrome now refers to the genetic disorder caused by a germline variant in one of these DNA MMR genes, distinguishing it from other familial clusters of CRC.

In 2009, a germline deletion in the EPCAM gene was identified as another cause of MSH2 inactivation in the absence of a germline pathogenic variant in MSH2. The variant in EPCAM led to hypermethylation of the MSH2 promoter. Thus, EPCAM, which is not a DNA MMR gene, is also implicated in Lynch syndrome and is now routinely tested in at-risk patients along with the DNA MMR genes listed above.

##### Defining Lynch syndrome families

Families with a preponderance of CRC and a possible genetic predisposition were initially categorized as having Lynch syndrome based on family history criteria, as well as personal history of young-onset CRC. With the advent of molecular tumor diagnostic testing and the discovery of the germline alterations associated with Lynch syndrome, the clinical criteria have currently fallen out of favor due to their underperformance. However, their use, or the risk estimates provided by the Lynch syndrome prediction models, may be applicable among individuals without personal history of cancer but with a family history suggestive of Lynch syndrome, or for those individuals with CRC but without available tumor for molecular diagnostic testing. (Refer to the Universal tumor testing to screen for Lynch syndrome and the Clinical risk assessment models that predict the likelihood of an MMR gene pathogenic variant sections of this summary for more information.)

The first criteria for defining Lynch syndrome families were established by the International Collaborative Group meeting in Amsterdam in 1990 and are known as the Amsterdam criteria.[248] These research criteria were limited to diagnoses of familial CRC. In 1999, the Amsterdam criteria were revised to include some extracolonic cancers, predominantly endometrial cancer.[251] These criteria provide a general approach to identifying Lynch syndrome families, but they are not considered comprehensive; nearly half of families meeting the Amsterdam criteria do not have detectable pathogenic variants.[252]

Amsterdam criteria I (1990):
1. One family member diagnosed with CRC before age 50 years.
2. Two affected generations.
3. Three affected relatives, one of them an FDR of the other two.
4. FAP should be excluded.
5. Tumors should be verified by pathological examination.

Amsterdam criteria II (1999):
- Same as Amsterdam criteria I, but tumors of the endometrium, small bowel, ureter, or renal pelvis can be used to substitute an otherwise qualifying CRC.

These criteria were subsequently used beyond research purposes to identify potential candidates for microsatellite and germline testing. However, the Amsterdam criteria failed to identify a substantial proportion of Lynch syndrome kindreds; families that fulfilled Amsterdam criteria I but did not have evidence of MSI and were without a pathogenic germline variant in a DNA MMR gene, were referred to as familial colorectal cancer type X (FCCX).

With the hallmark feature of MSI associated with Lynch syndrome tumors, and the limitations of the Amsterdam criteria related to low sensitivity, the Bethesda guidelines were introduced in 1997. The Bethesda guidelines are a combination of clinical, histopathologic, and family cancer history features that identify cases of CRC that warrant MSI tumor screening. The Bethesda guidelines (with a subsequent revision in 2004) were formulated to target patients in whom evaluation of CRC tumors for MMR deficiency should be considered, and to improve the sensitivity of clinical criteria used to identify individuals who are candidates for mutational DNA analysis.[253,254] (Refer to the Genetic and molecular testing for Lynch syndrome section of this summary for more information about testing for MSI and IHC.)

Bethesda guidelines (1997):
1. Cancer in families that meet the Amsterdam criteria.
2. The presence of two Lynch syndrome–related cancers, including synchronous and metachronous CRCs or associated extracolonic cancers. [Note: Endometrial, ovarian, gastric, hepatobiliary, or small-bowel cancer or transitional cell carcinoma of the renal pelvis or ureter.]
3. The presence of CRC and an FDR with CRC and/or Lynch syndrome–related extracolonic cancer and/or a colorectal adenoma; one of the cancers diagnosed before age 45 years, and the adenoma diagnosed before age 40 years.
4. CRC or endometrial cancer diagnosed before age 45 years.
5. Right-sided CRC with an undifferentiated pattern (solid/cribriform) on histopathology diagnosed before age 45 years. [Note: Solid/cribriform defined as poorly differentiated or undifferentiated carcinoma composed of irregular, solid sheets of large eosinophilic cells and containing small gland-like spaces.]
6. Signet-ring–cell CRC diagnosed before age 45 years. [Note: Composed of more than 50% signet ring cells.]
7. Adenomas diagnosed before age 40 years.

Revised Bethesda guidelines (2004)*:
1. CRC diagnosed in an individual younger than 50 years.
2. Presence of synchronous, metachronous colorectal, or other Lynch syndrome–associated tumors.**
3. CRC with MSI-high (MSI-H) pathological associated features diagnosed in an individual younger than 60 years. [Note: Presence of tumor-infiltrating lymphocytes, Crohn-like lymphocytic reaction, mucinous/signet-ring differentiation, or medullary growth pattern.]
4. CRC or Lynch syndrome–associated tumor** diagnosed in at least one FDR younger than 50 years.
5. CRC or Lynch syndrome–associated tumor** diagnosed at any age in two FDRs or second-degree relatives (SDRs).

*One criterion must be met for the tumor to be considered for MSI testing.

**Lynch syndrome–associated tumors include colorectal, endometrial, stomach, ovarian, pancreatic, ureter and renal pelvis, biliary tract, and brain tumors; sebaceous gland adenomas and keratoacanthomas in Muir-Torre syndrome; and carcinoma of the small bowel.[254,255]

Although the Bethesda guidelines were able to identify a higher proportion of Lynch syndrome carriers than the Amsterdam criteria, they still missed approximately 30% of Lynch syndrome families.[256] Furthermore, the Bethesda guidelines were not consistently used in clinical practice to identify the subset of individuals with CRC who should have MSI tumor testing; the guidelines were deemed cumbersome and difficult to remember by health care providers and the opportunity to refer for genetic evaluation was missed.[257]

With the advent of alternative approaches, including universal testing of all newly diagnosed cases of CRC for MSI (regardless of age at diagnosis or family history of cancer), clinical criteria for Lynch syndrome have been rendered obsolete. While the Bethesda guidelines were intended for individuals with cancer, their performance in individuals unaffected by cancer may still be of use. Given the limited modalities available to assess unaffected individuals for Lynch syndrome, family history and the use of clinical criteria may be appropriate in identifying those who warrant further genetic evaluation and testing.

###### Clinical risk assessment models that predict the likelihood of an MMR gene pathogenic variant

Because health care providers ineffectively use clinical criteria to select individuals with CRC for genetic referral and evaluation for Lynch syndrome, computer-based clinical prediction models were developed and introduced in 2006 as alternative modalities to provide systematic genetic risk assessment for Lynch syndrome. The risk models include the PREMM (PREdiction Model for gene Mutations) models (https://premm.dfci.harvard.edu/), MMRpredict (http://hnpccpredict.hgu.mrc.ac.uk), and MMRpro (https://projects.iq.harvard.edu/bayesmendel/mmrpro).[258-261]

Four models (PREMM[1,2,6], PREMMplus, MMRpredict, and MMRpro) quantify an individual’s probability of carrying a pathogenic variant in one of the following MMR genes: MLH1, MSH2, and MSH6. The PREMM(1,2,6) model was subsequently extended to include prediction of pathogenic PMS2 and EPCAM variants (PREMM5).[261] While PREMM5, MMRpredict, and MMRpro are specific to Lynch syndrome, PREMMplus quantifies an individual’s risk of having a pathogenic variant in one of 19 genes (including all five Lynch syndrome genes).[262] However, it is unclear if one of these models is preferred for predicting when an individual has Lynch syndrome.

While the models were all created for the same purpose, they differ in the way they were developed and the variables used to predict risk. In addition, the populations in which they were validated reveal each model’s specific characteristics that may impact accuracy.[262-272] Deciding on which model to use in the risk assessment process depends on both the clinical setting in which it is applied and the patient population that is being evaluated. MMRpro’s predictions account for family size and unaffected relatives, the possibility of including molecular tumor data in the risk analysis, and the option of predicting pathogenic variant carrier status following germline testing. The major limitation in the widespread use of MMRpro in routine practice is the need to input data from the entire pedigree (including individuals without cancer), which is relatively time-consuming. Its best use is likely to be as a genetic counseling tool in a specialized high-risk clinic or research setting, as its accessibility is also limited. PREMM’s major advantages include that it is easy to use, available as an online tool, and has been extensively validated, including in a self-administered setting in a GI clinic.[273] It includes risk prediction based on personal and family cancer history up to SDRs for a broad spectrum of extracolonic cancers. However, the model does not consider family size and may overestimate the likelihood of a pathogenic variant in a pedigree that includes multiple elderly family members who are unaffected by CRC or endometrial cancer. Given the ease with which one can use the PREMM model (it has been deemed less time-consuming than MMRpro in validation studies),[268] it may be used by diverse health care providers whose primary aim is to identify patients who should be referred for genetic evaluation, and is likely to be most useful in the pretesting decision-making process. MMRpredict’s use may be limited overall because of its less accurate risk estimates [274] when used to evaluate families with Lynch syndrome–associated cancers and older individuals affected by CRC; the model was developed using data from young-onset CRC cases (patients diagnosed at age <55 y) and did not include extracolonic malignancies. Furthermore, the model does not incorporate tumor testing results or provide post-hoc risk estimates based on gene sequencing results. Lastly, PREMMplus assesses the likelihood of finding a pathogenic variant on a multigene panel of 19 high- and moderate-penetrance genes, and it is not limited to genes associated with CRC.[262]

Overall, there is ample evidence that each of the models has superior performance characteristics of sensitivity, specificity, and positive and negative predictive values that support their use when compared with the existing clinical guidelines for diagnosis and evaluation of Lynch syndrome. Because of the diverse clinical settings in which a health care provider could assess an individual for Lynch syndrome, prediction models offer a potentially feasible and useful strategy to systematically identify at-risk individuals, whether or not they are affected with CRC.

##### Summary

In conclusion, the presence of tumor MSI in CRCs, along with a compelling personal and family history of cancer, warrants germline genetic testing for Lynch syndrome, and most clinical practice guidelines provide for such an approach. These guidelines combine genetic counseling and testing strategies with clinical screening and treatment measures. Providers and patients alike can use these guidelines to better understand available options and key decisions. (Refer to Table 13 for more information about practice guidelines for diagnosis and colon surveillance in Lynch syndrome.)

#### Genetics of Lynch syndrome

The genetics of both the tumor and the germline have an important role in the development and diagnosis of Lynch syndrome. Tumor DNA in Lynch syndrome–associated tumors exhibits characteristic MSI, and in these cases, there is typically loss of IHC expression for one or more of the proteins associated with the MMR genes. Molecular testing with MSI and/or IHC has been adopted as a universal screen for diagnosis of Lynch syndrome in newly diagnosed patients with CRC and endometrial cancer. IHC testing results can potentially direct gene-specific germline testing. Many genetic testing laboratories offer multigene (panel) tests that simultaneously test for pathogenic variants in all of the Lynch syndrome–associated genes (and often additional genes associated with inherited cancer susceptibility).

##### Genetic and molecular testing for Lynch syndrome

###### MSI

The presence of MSI in colorectal tumor specimens is a hallmark feature of Lynch syndrome and can be cause for suspicion of a germline pathogenic MMR gene variant. Microsatellites are short, repetitive sequences of DNA (mononucleotides, dinucleotides, trinucleotides, or tetranucleotides) located throughout the genome, primarily in intronic or intergenic sequences.[275,276] The term MSI is used when colorectal, endometrial, or metastatic tumor DNA [277] shows insertions or deletions in microsatellite regions when compared with normal tissue. MSI indicates probable defects in MMR genes, which may be due to somatic variants, germline variants, or epigenetic alterations.[278] In most instances, MSI is associated with absence of protein expression of one or more of the MMR proteins (MSH2, MLH1, MSH6, and PMS2). However, loss of protein expression may not be seen in all tumors with MSI and not all tumors with loss of protein expression on IHC will be microsatellite unstable.

Certain histopathologic features are strongly suggestive of MSI phenotype, including the presence of tumor-infiltrating lymphocytes (refer to Figure 4), Crohn-like reaction, mucinous histology, and histological heterogeneity.[279]

Figure 4. Tumor-infiltrating lymphocytes are a histopathologic feature suggestive of microsatellite instability.

Histopathology slide of a colorectal tumor under a microscope, showing lymphocytes and cell nuclei in the tumor.

Initial designation of a colorectal adenocarcinoma as microsatellite unstable was based on the detection of a specified percentage of unstable loci from a panel of three dinucleotide and two mononucleotide repeats that were selected at a National Institutes of Health (NIH) Consensus Conference and referred to as the Bethesda panel. If more than 30% of a tumor's markers were unstable, it was scored as MSI-H; if at least one, but fewer than 30% of markers were unstable, the tumor was designated MSI-low (MSI-L). If no loci were unstable, the tumor was designated microsatellite stable (MSS). Most tumors arising in the setting of Lynch syndrome will be MSI-H.[280] The clinical relevance of MSI-L tumors remains controversial; the probability is very small that these tumors are associated with a germline pathogenic variant in an MMR gene.

The original Bethesda panel has been replaced by a pentaplex panel of five mononucleotide repeats,[280] which has improved the detection of MSI-H tumors.

(Refer to the Prognostic and therapeutic implications of MSI section of this summary for more information about the treatment implications of MSI testing.)

(Refer to the Universal tumor testing to screen for Lynch syndrome section of this summary for information about the utilization of MSI status in the diagnostic workup of a patient with suspected Lynch syndrome.)

###### IHC

IHC methods are cheaper, easier to understand, and more widely available as a surrogate for MSI and, for these reasons, have replaced polymerase chain reaction (PCR)–based MSI testing in most institutions. IHC is performed in the colorectal or endometrial tumor (or metastatic sites) [277] for protein expression using monoclonal antibodies for the MLH1, MSH2, MSH6, and PMS2 proteins. Isolated loss of expression of any one of these proteins may suggest which specific MMR gene is altered in a particular patient.[281-284] However, certain proteins can form heterodimers (or have other binding partners) and yield loss of two proteins expressed on IHC.

MSI can lead to nucleotide-pairing slippage (looping) in which single nucleotide mispairs are introduced. Heterodimers of MMR proteins are formed to identify the errors and bind the DNA at these sites.[278,285] For example, MSH2 protein complexes with MSH6 protein to form MutSα, which has the main ability to repair single base pair mismatches and single base pair loop-out lesions that can occur during the replication of a mononucleotide repeat sequence. In the absence of MSH6 protein, the MSH2 protein will dimerize with the MSH3 protein forming the MutSβ complex, which can trigger repair of larger loop-out DNA mismatches, but also has some overlapping activity to repair lesions usually repaired by MutSα.

Figure 5. Immunohistochemical tumor testing for protein expression of the mismatch repair genes associated with Lynch syndrome, depicted for a single patient with colorectal cancer. Protein expression is preserved for MSH2 and MSH6 (inset) and absent for MLH1 and PMS2 (inset). Absence of MMR protein expression is suggestive of Lynch syndrome and warrants additional evaluation.

Protein stains of normal and colorectal tumor tissue are shown for a single patient. The stains from the tumor (in four insets) show the presence of MSH2 and MSH6 (the dark stain is visible) and absence of MLH1 and PMS2 (the dark stain is not visible).

As a result, when the germline pathogenic variant is in the MSH2 gene, the tumor IHC may not express both MSH2 and MSH6, as the latter protein requires binding to MSH2 for stability. In this case, if no pathogenic variant is found in either gene, germline pathogenic variant testing for EPCAM should be considered if it was not already included. Approximately 20% of patients with absence of MSH2 and MSH6 protein expression by IHC and no MSH2 or MSH6 pathogenic variant identified will have germline deletions in EPCAM.[286] The latter mechanism accounts for approximately 5% of all Lynch syndrome cases.[286] A deletion of one exon 9 allele in the EPCAM (TACSTD1) gene, which is immediately upstream of MSH2's start site and in the same orientation, can lead to transcriptional read-through and methylation of the MSH2 promoter. This can lead to subsequent silencing of MSH2 in any tissue that expresses EPCAM. The presence of EPCAM pathogenic variants showing similar methylation-mediated MSH2 loss has been reported in numerous families.[287] On the strength of these observations, germline EPCAM testing is performed in patients with loss of MSH2 protein expression on IHC testing of their CRCs but who lack a detectable MSH2 germline pathogenic variant and is included with MSH2 testing in all colon cancer gene panels. For more information, see the EPCAM section.

In patients with no variants in any of these genes, tumor sequencing may reveal biallelic, somatic MSH2 variants. For more information, see the Somatic biallelic mismatch repair deficiency (sometimes called Lynch-like syndrome) section.

Similarly, the loss of MLH1 (either by germline pathogenic variant or hypermethylation of the MLH1 promoter) results in the absence of expression of both MLH1 and PMS2 proteins in the tumor. The most common abnormal IHC pattern for DNA MMR proteins in colorectal adenocarcinomas is loss of expression of MLH1 and PMS2. PMS2 and MLH1 function as a stable heterodimer known as MutLα. MutLα binds to MutSβ and guides excision repair of the newly synthesized DNA strand.[278] A functional defect in MLH1 results in degradation of both MLH1 and PMS2, while a defect in PMS2 negatively affects only PMS2 expression. Thus, a loss of MLH1 and PMS2 indicates that there is an alteration in MLH1 (promoter hypermethylation or germline variant), while loss of PMS2 expression often indicates that there is a germline PMS2 variant. However, among 88 individuals with PMS2-deficient CRC, PMS2 germline pathogenic variant testing followed by MLH1 germline pathogenic variant testing revealed pathogenic PMS2 variants in 49 individuals (74%) and MLH1 pathogenic variants in 8 individuals (12%).[288] Eighty-three percent of the alterations in MLH1 were missense variants, but two relatives carried identical MLH1 variants, and one individual, who developed two tumors with retained MLH1 expression, carried an intronic variant that led to skipping of exon 8.[288] Therefore, in CRCs with solitary loss of PMS2 expression, an MLH1 germline pathogenic variant should be sought if no PMS2 germline variant is found. Tumors with MSI and loss of MSH2 and MSH6 protein expression are generally indicative of an underlying MSH2 germline variant (inferred MSH2 pathogenic variant). Unlike the case with MLH1, MSI with MSH2 loss is rarely associated with somatic hypermethylation of the promoter.

Unlike MLH1 and MSH2 (which both dimerize with other proteins or have other binding partners), germline pathogenic variants in MSH6 and PMS2 result in the isolated loss of those specific proteins by IHC. However, tumors from MSH6 pathogenic variant carriers may not display the MSI phenotype at a frequency as high as MLH1 and MSH2 carriers (despite an inactive DNA MMR system), as there are pathogenic missense variants that do not completely abrogate protein expression yielding false negative results by IHC testing.[267,289] In a study that reported tumor testing results among MMR germline carriers enrolled through the Colon Cancer Family Registry, 7 of 24 carriers (28%) with MSH6 pathogenic variants had tumors that displayed normal protein expression on IHC staining. IHC tumor testing was more informative for MLH1 and MSH2 pathogenic variant carriers in which 93% of MLH1 carriers had correlating loss of MLH1 protein expression and 96% of MSH2 carriers had loss of MSH2 protein expression.[267]

In some cases, tumors manifest MSI and/or IHC shows loss of DNA MMR protein expression, but no germline pathogenic variant is identified. This tumor phenotype is predominantly due to biallelic somatic inactivation of the DNA MMR genes and is not a pathogenic germline alteration. This phenomenon has been labeled Lynch-like syndrome (sometimes called LLS in the literature), although this terminology may cause confusion since this term represents a mechanism of sporadic carcinogenesis, rather than a stand-alone genetic syndrome. For more information, see the Somatic biallelic mismatch repair deficiency (sometimes called Lynch-like syndrome) section.

Table 9. Protein Loss and Potential Germline Defect(s)

Loss of Protein Expression | Germline MMR Defect Predicted by IHC Protein Expression Loss
| MLH1 | MSH2 | MSH6 | PMS2 | EPCAM
MLH1/PMS2 | X
MSH2/MSH6 | | X | | | X
MSH6 | | | X
PMS2 | X | | | X
MLH1 | X | | | X
MSH2 | | X | X

IHC = immunohistochemistry; MMR = mismatch repair.

###### Somatic MLH1 hypermethylation

It is important to recognize that hypermethylation of the MLH1 promoter, a somatic event confined to the tumor, can lead to abnormal protein expression of MLH1 on IHC. Approximately 10% to 15% of sporadic CRC cases have a microsatellite unstable tumor phenotype due to MLH1 hypermethylation and are not heritable. These sporadic MSI colon cancers [290] have a generalized excess of DNA methylation referred to as CIMP.[291] (Refer to the CIMP and the serrated polyposis pathway section in the Introduction section of this summary for more information.) Because loss of MLH1 protein expression on IHC occurs in both Lynch syndrome and sporadic tumors, its specificity for predicting germline MMR gene variants is lower than for the other MMR proteins, and additional molecular testing is often necessary to clarify the etiology of MLH1 absence.

BRAF pathogenic variants have been detected in 68% of CRC tumors with MLH1 promoter hypermethylation and very rarely, if ever, in CRC from patients with Lynch syndrome.[292-295] This suggests that detection of somatic BRAF V600E variant detection in CRC may be useful in excluding individuals from germline variant testing. As a result, BRAF V600 testing and/or MLH1 hypermethylation assays are increasingly used in universal Lynch syndrome–testing algorithms in an attempt to distinguish between an absence of MLH1 protein expression caused by hypermethylation and germline MLH1 pathogenic variants. Making such a distinction is also a more cost-effective approach in excluding individuals from germline testing.

###### Somatic biallelic mismatch repair deficiency (sometimes called Lynch-like syndrome)

Prior to the widespread use of somatic tumor sequencing, somatic MLH1 hypermethylation was thought to be the only major sporadic pathway for a tumor to have MSI-H/MMR-deficient (MMR-D) biology. It was presumed that any MSI-H/MMR-D CRC or endometrial cancer with patterns of MMR deficiency (other than MLH1/PMS2 loss) was due to Lynch syndrome, even if a germline pathogenic variant in an MMR gene could not be identified. However, as IHC is more routinely performed for all CRCs and endometrial cancers, it has become clear that other patterns of MMR deficiency can arise via sporadic mechanisms, typically by somatic biallelic MMR gene inactivation.[296] This phenomenon has been labeled Lynch-like syndrome (sometimes called LLS in the literature), although this terminology may cause confusion since this term represents a mechanism of sporadic carcinogenesis, rather than a stand-alone genetic syndrome.

Work from the Ohio Colorectal Cancer Prevention Initiative found that 88.4% of CRCs and 100% of endometrial cancers with unexplained MMR-D statuses (i.e., cancers did not have a germline pathogenic variant in an MMR gene or MLH1 promoter hypermethylation) had somatic biallelic MMR deficiency found on somatic tumor sequencing.[297,298] In an additional series of MMR-D cancers (mostly CRCs and endometrial cancers) that underwent paired germline and somatic MMR variant analyses, somatic biallelic genetic alterations were found in 49% of the tumors that lacked causal germline pathogenic variants, MLH1 promoter hypermethylation, and BRAF V600E variants.[299]

When CRCs, endometrial cancers, or other tumors have unexplained MMR-deficiency, in which somatic sequencing fails to identify somatic biallelic MMR deficiency, it is possible that a small fraction of these cases could represent occult Lynch syndrome (or other forms of unidentifiable inherited cancer risk). In these cases, it is recommended that patients' clinical and family histories be carefully examined for possible inherited cancer risk. This will help determine if patients and their families will be clinically managed as if they have suspected Lynch syndrome. In these cases, careful scrutiny of any germline MMR gene VUS is also warranted to assess whether these VUSs could harbor pathogenicity. For more information about VUS genetic test results, see the Value of testing an affected family member first section in Cancer Genetics Risk Assessment and Counseling.

Some studies have attempted to define the risk of CRC and other Lynch syndrome–associated malignancies in cohorts of individuals with Lynch-like syndrome. However, the ability to clinically interpret these data may be limited since these populations presumably include a mix of individuals with sporadic MMR-D cancers and others with inherited cancer risk.[300,301]

###### IHC in constitutional mismatch repair deficiency (CMMRD) syndrome

In contrast with Lynch syndrome (which is defined by the presence of a single, germline, heterozygous, deleterious variant in an MMR gene), rarely, individuals can have deleterious germline variants in both alleles of the same MMR gene. These cases can present with homozygous or compound heterozygous genotypes. This is termed biallelic mismatch repair deficiency (BMMRD) or constitutional mismatch repair deficiency (CMMRD). The likelihood of CMMRD involving homozygous MMR gene pathogenic variants will inevitably be higher among consanguineous unions. Rates of consanguinity may be higher in rural and geographically and/or culturally isolated populations.[302]

Tumor studies yield characteristic abnormalities. In a series of 28 patients with CMMRD,[115] 17 brain tumors showed loss of staining for MMR protein in normal stromal cells and in neoplastic cells. This differs from tumors in patients with Lynch syndrome, in which normal staining is retained in nontumor cells. In contrast to this characteristic feature seen with IHC, PCR-based MSI analysis was not reliable, as 20 of 28 tumors from patients with CMMRD were MSS. Essentially all of the MSI-H tumors were colon cancers.

The PMS2 gene is markedly overrepresented in cases of CMMRD. It has been suggested that the presence of homozygosity in other MMR gene variants is a prenatally lethal state, while milder expression of PMS2 variants is consistent with survival when present in both parental alleles.

For more information about CMMRD's clinical phenotype, see the CMMRD section.

Table 10. Hereditary Colorectal Cancer (CRC) Syndromes and Associated Tumor Phenotypes^a^

Clinical Phenotype | Pathogenic Germline Variant in DNA MMR | Somatic Inactivation of DNA MMR | Tumor Phenotype
Lynch syndrome | Present in one allele | Present in one allele | MSI
Sporadic CRC with hypermethylation of MLH1 promoter | Absent | +BRAF | MSI
CMMRD | Present in two alleles | Absent | MSI (tumor and normal tissue)
Somatic biallelic MMR deficiency (sometimes called Lynch-like syndrome) | Absent | Present in two alleles | MSI
FCCX | Absent | Absent | MSS

CMMRD = constitutional mismatch repair deficiency; FCCX = familial colorectal cancer type X; MMR = mismatch repair; MSI = microsatellite instability; MSS = microsatellite stable.

^a^Adapted from Carethers et al.[301]

###### Constitutional epimutation

While somatic hypermethylation of the MLH1 promoter is acquired and not uncommon, examples of MLH1 promoter hypermethylation have been described in the germline and are generally not associated with a stable Mendelian inheritance. This constitutional methylation of MMR genes occurs most often in MLH1 and, to a lesser extent, MSH2 and is termed constitutional epimutation.[303] A constitutional epimutation (also referred to as a primary epimutation) is an acquired alteration in normal tissue that silences an active gene or activates an inactive gene.[304] Such epimutations occur most often in maternal alleles. In some cases, all somatic cells appear involved, while in others there is evidence of mosaicism. Tumors in patients with primary epimutations are generally indistinguishable from those otherwise typical of Lynch syndrome germline variant carriers, including age at onset, tumor spectrum, and presence of abnormal MSI and IHC. Since these are not inherited in a Mendelian fashion, antecedent family history of tumors is minimal, and risk to offspring somewhat unpredictable. Epimutations present in a de novo case seem to typically be "erased" in the process of gametogenesis and to not be passed to the next generation. Very rare cases of inherited MLH1 epimutations have been reported.[305,306]

Interpreting molecular alterations in tumors and distinguishing the likely primary epimutation cases from those of sporadic MSI poses significant challenges. Most instances of absence of MLH1 expression are caused by the sporadic hypermethylation of the MLH1 promoter. Rare instances of a de novo constitutional epimutation in MLH1 [307] or an inherited germline MLH1 methylation [308] add some complexity to the interpretation of MSI associated with absence of MLH1 expression. Akin to sporadic MSI, primary epimutation tumors show methylation of the MLH1 promotor and may show BRAF variants as well. As noted above, family history of cancer in such cases tends to be minimal or absent, as in true sporadic MSI. Distinguishing such cases from sporadic cases may call for assaying normal tissue (e.g., blood or normal colon mucosa) for evidence of MLH1 methylation, which will be absent from true sporadic cases and absent from carriers of conventional Lynch syndrome MMR pathogenic variants.

Such MLH1-predominant primary epimutations are to be distinguished from secondary epimutations such as those occurring when MSH2 is methylated as a consequence of inherited variants in the upstream EPCAM gene. (Refer to the EPCAM section of this summary for more information.)

###### Molecular diagnostic tumor testing to screen for Lynch syndrome in clinical practice

While many molecular pathology laboratories can assess both MSI and IHC, an approach that uses IHC testing as the initial screen for defective MMR activity has been favored because it is less labor intensive and more cost-effective.[309,310] Part of this rationale is that the information provided by IHC may target germline genetic testing toward one specific MMR gene (with the exception of loss of MLH1 expression) as opposed to a comprehensive testing strategy of all Lynch syndrome–related MMR genes that would be directed by the use of MSI alone.[256,309,311-314] While MSI testing was originally favored in the oncologic evaluation of individuals with CRC for its prognostic and therapeutic implications, screening for Lynch syndrome can be more effectively directed by IHC testing.

###### Universal tumor testing to screen for Lynch syndrome

Use of MSI and/or IHC testing in all newly diagnosed cases of CRC, regardless of the age at diagnosis or family history of cancer, increases the sensitivity of the initial screen for Lynch syndrome. This approach is more sensitive than existing clinical criteria, as many individuals with Lynch syndrome are diagnosed at older ages (>50 y) and have less striking family histories of CRC than previously appreciated. This universal testing of colorectal (and endometrial) tumors using either MSI or IHC testing has been recommended by many professional organizations and is being widely adopted.[123,315-318]

Genetic risk assessment and MMR gene variant testing in individuals with newly diagnosed CRC can lead to improved outcomes for the patient and at-risk family members. Dating back to 2009, the Evaluation of Genomic Applications in Practice and Prevention (EGAPP), a project developed by the Office of Public Health Genomics at the Centers for Disease Control and Prevention (CDC), reported that there was sufficient evidence to recommend offering tumor screening for Lynch syndrome to individuals with newly diagnosed CRC to reduce morbidity and mortality in relatives.[319,320] At that time, there was insufficient evidence to recommend a specific testing strategy between MSI and IHC.

Several studies have demonstrated the feasibility of universal screening for Lynch syndrome. Initial experience from one institution found that among 1,566 patients screened using MSI and IHC, 44 patients (2.8%) had Lynch syndrome. For each proband, an average of three additional family members were subsequently diagnosed with Lynch syndrome.[256] A subsequent pooled analysis of 10,206 incident CRC patients tested with MSI/IHC as part of four large studies revealed a pathogenic variant detection rate of 3.1%.[321] This study compared four strategies for tumor testing for the diagnosis of Lynch syndrome: (1) testing all individuals meeting at least one criterion of the Bethesda guidelines; (2) testing all individuals meeting Jerusalem recommendations;[322] (3) testing all individuals with CRC aged 70 years or younger, or older than 70 and meeting at least one criterion of the Bethesda guidelines; and (4) universal testing of all individuals with CRC.[321] Tumor testing with MSI involved panels individualized at each institution and IHC involved testing all four of the DNA MMR genes involved with Lynch syndrome, across all institutions. The strategy of tumor testing in all individuals diagnosed with CRC at age 70 years or younger and testing individuals over age 70 who met one of the revised Bethesda guidelines yielded a sensitivity of 95.1%, a specificity of 95.5%, and a diagnostic yield of 2.1%. This strategy missed 4.9% of Lynch syndrome cases, but 34.8% fewer cases required IHC/MSI testing, and 28.6% fewer cases underwent germline testing than in the universal approach.

The consideration to further stratify the recommendation for molecular tumor testing by age (i.e., 70 y) warrants attention as it influences the cost-effectiveness of universal screening strategy.

Loss of MLH1 and PMS2 due to somatic hypermethylation is not uncommon, and is more frequently detected with increasing age at CRC diagnosis.[323] Therefore, additional molecular tumor testing including BRAF and MLH1 hypermethylation testing is recommended in cases in which there is loss of MLH1 and PMS2 expression on IHC, thereby decreasing the number of individuals referred for unnecessary germline genetic testing. A testing strategy including MLH1 hypermethylation analyses in individuals aged 70 years or younger with CRC who had loss of MLH1 on IHC was shown to be cost-effective in a population-based study of 1,117 individuals.[324]

Screening individuals with CRC for Lynch syndrome is most often performed in a stepwise fashion based on IHC tumor testing results that evaluate protein expression for the four MMR genes related to Lynch syndrome. One proposed strategy is summarized in Figure 6. This framework does not incorporate a germline testing approach that simultaneously evaluates multiple cancer susceptibility genes (multigene [panel] testing), which may be useful in select patient populations. (Refer to the Multigene [panel] testing section of this summary for more information.)

Figure 6. A proposed strategy to evaluate individuals with colorectal cancer for Lynch syndrome based on immunohistochemical tumor testing results. Adapted from Geiersbach KB, Samowitz WS. Microsatellite instability and cancer. Arch Pathol Lab Med 135(10):1269-77, 2011.

Flowchart showing a multi-step process for evaluating an individual with colorectal cancer for Lynch syndrome.

Clinicians are increasingly utilizing tumor sequencing to advance therapeutic decisions in a more personalized approach, particularly in patients with metastatic disease. The performance of next-generation tumor sequencing (NGS) of CRCs for the detection of Lynch syndrome was compared with existing screening protocols that include MSI testing and IHC staining (with BRAF p.V600E testing) in 419 CRC cases recruited in a multicenter, population-based study.[325] Twelve participants were identified as Lynch syndrome carriers by germline DNA testing and all were correctly identified by tumor sequencing, while MSI plus BRAF testing and IHC plus BRAF testing missed five and six Lynch syndrome cases, respectively. Tumor sequencing had a higher sensitivity than IHC plus BRAF testing (100% vs. 89.7%; P = .04) and MSI plus BRAF testing (100% vs. 91.4%; P = .07) while specificity was comparable across all strategies (95.3% for tumor sequencing, 94.6% for IHC plus BRAF, and 94.8% for MSI plus BRAF; P = not significant). In a validation cohort of 46 known Lynch syndrome pathogenic variant carriers with CRC, tumor sequencing yielded similar results and correctly identified 100% of carriers. In addition, the authors highlighted potential therapeutic implications by reporting on somatic alterations identified by tumor sequencing in 283 participants. This study suggested that tumor sequencing is a highly effective mode of identifying Lynch syndrome; however, the cost-effectiveness of this strategy remains to be determined.

A 2019 retrospective study using data from a large, community-based, integrated U.S. health care system compared the diagnostic performance of age-restricted screening strategies for Lynch syndrome by reflex MMR IHC of all CRCs versus a universal screening strategy without an upper age limit.[326] Lynch syndrome identification decreased substantially after age 70 years to age 75 years, with minimal incremental gain after age 80 years. The number of CRCs needed to be screened to identify one Lynch syndrome case was 20 among patients diagnosed with CRC at age 50 years or younger but increased to 208 for those with CRC at age 71 years to age 80 years, and 668 for those diagnosed after age 80 years.

###### Cost-effectiveness of universal tumor screening for Lynch syndrome

Results are available from a Markov model that incorporated the risks of colorectal, endometrial, and ovarian cancers to estimate the effectiveness and cost-effectiveness of strategies to identify Lynch syndrome among individuals aged 70 years or younger with newly diagnosed CRC.[310] The strategies incorporated in the model were based on clinical criteria, prediction algorithms, and tumor testing or up-front germline pathogenic variant testing followed by directed screening and risk-reducing surgery. IHC followed by BRAF pathogenic variant testing was the preferred strategy in this study. An incremental cost-effectiveness ratio of $36,200 per life-year gained resulted from this strategy. In this model, the number of relatives tested (3–4) per proband was a critical determinant of both effectiveness and cost-effectiveness. These results were similar to earlier analyses conducted by EGAPP which found that the most cost-effective approach was to test all tumors for absence of protein expression of MSH2, MLH1, MSH6, and PMS2 followed by targeted germline testing of MSH2, MLH1, or MSH6 offered depending on which protein was absent. If there was absence of MLH1, testing was offered for BRAF variant-negative tumors.[320]

NCCN 2024 guidelines support using universal screening on all CRCs to help identify individuals who may have Lynch syndrome. Universal screening can include the following testing methods: IHC testing, MSI testing, and comprehensive tumor NGS panel testing.[123] Universal screening in all individuals irrespective of age was associated with a doubling of incremental cost per life-year saved compared with screening only those younger than 70 years.[310] The authors of this analysis conclude that screening individuals younger than 70 years appears reasonable, while screening all individuals regardless of age might also be acceptable, depending on willingness to pay.

However, it is important to note that the conclusions from this study were contingent upon the number of at-risk relatives who underwent germline testing (through a process known as cascade screening) based on the identification of a germline MMR gene variant in the index case of CRC in the family. In their model, to meet the accepted $50,000 cost-effective threshold, testing a minimum of three to four relatives was necessary.[310] This emphasizes the importance of provider-to-patient communication, family communication, and the need to ensure improved uptake of germline testing in Lynch syndrome families with a known causative gene. (Refer to the Psychosocial Issues in Hereditary Colon Cancer Syndromes section of this summary for more information about family communication and uptake of genetic testing in families with Lynch syndrome.)

Another study addressed the cost-effectiveness of testing for pathogenic variants in the Lynch syndrome–associated genes and evaluated 21 screening strategies, including clinical criteria, use of clinical Lynch syndrome prediction models, and molecular tumor testing.[327] The model included two steps: (1) measurement of the newly identified number of Lynch syndrome diagnoses; and (2) measurement of the life-years gained as a result of confirming Lynch syndrome in a healthy carrier. Among all of the strategies modeled, screening the proband with a predictive model such as PREMM(1,2,6) followed by IHC for MMR protein expression and germline genetic testing was the best approach, with an incremental cost-effectiveness ratio of $35,143 per life-year gained. Germline genetic testing on all probands was the most effective approach, but at a cost of $996,878 per life-year gained. The authors concluded that the initial step of Lynch syndrome screening should utilize a predictive model in the proband, and that both universal testing and general population screening strategies were not cost-effective screening strategies for Lynch syndrome.

Establishment of an upper age limit for universal tumor testing remains controversial. Some experts have endorsed testing only individuals with CRC who are younger than 70 years (reserving testing in individuals ≥70 y for only those meeting the revised Bethesda criteria; with this strategy, 5% of carriers would be missed).[328] However, others have advocated against an upper age limit for testing given the potential benefit to younger generations via cascade screening and the opportunity for increased surveillance and other prophylactic interventions in individuals found to carry a known familial pathogenic variant.

Another cost-effectiveness analysis was performed using data from 179 consecutive endometrial cancer patients diagnosed at or before age 70 years and screened with MMR IHC and reflex MLH1 promoter hypermethylation, among whom seven Lynch syndrome carriers (3.9%) were identified.[329] Only one of the seven Lynch syndrome probands was age 50 years or younger at endometrial cancer diagnosis. The authors calculated that screening women diagnosed with endometrial cancer at age 51 to 70 years resulted in an additional 29.3 life-years gained (on top of the 45.4 life-years gained by screening women diagnosed at age ≤50 y), and the incremental cost-effectiveness ratio for screening all diagnoses at age 70 years or younger versus diagnoses at age 50 years or younger was 5,252 euro per life-year gained. Universal tumor-based screening of all women aged 70 years or younger was also cost-effective, compared with strategies using the Bethesda guidelines to guide MMR and MSI testing with an incremental cost-effectiveness ratio of 6,668 euro per life-year gained.

The cost-effectiveness of universal tumor testing in both CRC and endometrial cancer is largely driven by the assumption of cascade screening through which other at-risk family members will be identified, tested, and subsequently pursue their own cancer risk reduction.[310]

The cost of germline genetic testing continues to decrease with advancements in DNA analyses, including simultaneous testing of multiple germline variants associated with malignancy, through multigene (panel) tests. As a result, additional cost-effective analyses using more updated data related to germline testing will need to be conducted. Multigene (panel) testing may become a more favorable and cost-effective approach in the future.

###### Considerations and limitations related to universal tumor testing for Lynch syndrome

While universal screening continues to be adopted nationally, there is significant variability in the uptake and approach to molecular testing. A 2011 survey of the National Society of Genetic Counselors revealed that more than 25% of respondents had some form of universal screening implemented at their center. Tumor screening methods varied; 34 (64.2%) of 53 centers started with IHC, 11 (20.8%) of 53 centers started with MSI testing, and 8 (15.1%) of 53 centers performed both tests on newly diagnosed colorectal tumors.[330] A 2012 survey suggested that some form of universal screening was being routinely performed at 71% of the National Cancer Institute (NCI) Comprehensive Cancer Centers, but utilization dropped to 15% among a random sample of community hospital cancer programs.[331]

Because adherence to universal screening for Lynch syndrome may be poor (many patients are not referred for genetic evaluation and testing), a prospective quality improvement study utilizing the Six Sigma conceptual framework was conducted to improve the implementation of universal genetic screening among young patients with CRC.[332] The main aim of the study was to increase the proportion of tumor studies for deficient MMR among patients with early-onset CRC (aged 18–50 y). The intervention involved patient and provider education, in addition to visual cues provided at point of care. The study demonstrated an improvement of 21.5% in the rate of IHC testing in young adults with CRC over the 12-month postintervention period compared with the preintervention period.

Studies reporting uptake of genetic testing for Lynch syndrome have largely focused on individuals and families who were selected for potential risk of Lynch syndrome based on family history or clinical characteristics. While universal tumor screening is increasingly being adopted to identify newly diagnosed patients who may have a germline variant, few studies have examined the uptake of genetic testing after universal tumor testing. An important implication of universal screening for Lynch syndrome is that it does not result in automatic germline testing in appropriate individuals. In the clinical setting, more follow-up by health care teams to facilitate referral to genetic counseling for patients with abnormal tumor screening results may improve completion of genetic testing.[333] Higher levels of patient completion of genetic testing after abnormal tumor screening may be associated with having genetic counselors involved in this process to disclose screen-positive results, provide counseling after tumor testing, or facilitate referrals.[334]

Subsequent genetic counseling requires coordination between the pathologist, the referring surgeon or oncologist, and a cancer genetics service. As an illustration, a population-based screening study found that only 54% of patients with an IHC-deficient tumor (that was BRAF pathogenic variant negative) ultimately consented to and proceeded with germline MMR testing.[335] One institution found 21 pathogenic variants among 1,100 patients who underwent routine MSI and IHC testing after a diagnosis of CRC. This study found markedly increased uptake of genetic counseling and germline MMR gene testing when both the surgeon and a genetic counselor received a copy of abnormal MSI/IHC results, especially when the genetic counselor played an active role in patient follow-up.[333]

In contrast to tumor testing, which is commonly performed without a patient's prior knowledge, germline genetic testing, such as germline testing for MMR pathogenic variants, generally includes genetic counseling and requires patient permission before it is performed. A cross-sectional survey of U.S. cancer programs (20 NCI–designated Comprehensive Cancer Centers and 49 community hospital cancer programs) found that, of those that performed MSI and/or IHC testing as part of standard pathological evaluation at the time of colon cancer diagnosis in all or select cases, none required written informed consent before tumor testing.[331]

###### Diagnostic strategies for all individuals diagnosed with endometrial cancer

Given the increased prevalence of endometrial cancer among carriers of MMR pathogenic variants, there is a growing consensus to screen patients with endometrial cancer for Lynch syndrome.

In a study that examined the feasibility and desirability of performing tumor screening of all endometrial cancers, regardless of age at diagnosis or family history of cancer, at least 2.3% (95% CI, 1.3%–4.0%) of newly diagnosed patients had Lynch syndrome.[336,337] Eight of thirteen cases diagnosed with Lynch syndrome were aged 50 years or older, eight did not meet published family history criteria for Lynch syndrome, and two would have been missed by MSI testing. Because of the increased prevalence of endometrial cancer and the results of this study, the authors support universal screening of endometrial cancers for Lynch syndrome. (Refer to the IHC section of this summary for more information about performing IHC for MMR protein expression.)

Another smaller study of 242 consecutive endometrial cases demonstrated a 4.5% (11/242) prevalence of MMR-deficient cases lacking somatic MLH1 promoter hypermethylation, including four cases (1.7%) with germline MMR variants, four cases (1.7%) with two somatic MMR alterations on NGS, and two cases (0.8%) with otherwise unexplained MMR-deficiency.[338] Such findings demonstrate that universal MMR tumor screening of endometrial cancers will identify individuals with underlying Lynch syndrome and a spectrum of non-Lynch syndrome cases with various forms of MMR-deficiency.

Another study prospectively evaluated universal IHC-based screening of both CRC and endometrial cancer cases, irrespective of age at diagnosis.[339] In both the tertiary and community settings, 1,290 CRC and 484 endometrial cancer cases were screened between 2011 and 2013. The study additionally calculated PREMM(1,2,6) and PREMM5 scores for all patients in whom a germline pathogenic variant was detected. Abnormal staining was observed in 22% of endometrial cancers and 18.8% of CRCs. After excluding those cases felt to be sporadic because of the presence of BRAF and/or hypermethylation of MLH1, 10.8 % of patients with CRC and 6.6% of patients with endometrial cancer were referred for genetic counseling. Lynch syndrome was diagnosed in 24 individuals (1.4%), 66% of whom had CRC. The overall detection rate of Lynch syndrome was 1.7% in endometrial cancer cases and 1.2% in CRC cases. Among Amsterdam criteria, Bethesda guidelines, PREMM(1,2,6), and PREMM5, the best performing model was PREMM5, which would have detected 82% of cases identified by universal screening.

The cost-effectiveness of tumor testing of women diagnosed with endometrial cancer was examined in a model-based simulation study and included IHC testing in the following scenarios: (1) diagnosis before age 50 years; (2) diagnosis before age 60 years; (3) any age at diagnosis with the presence of an FDR with any Lynch syndrome–associated cancer; and (4) all cases irrespective of diagnosis age and family history. Women fulfilling Amsterdam II criteria or those diagnosed before age 50 years with at least one FDR with any Lynch syndrome–associated cancer were directly referred for genetic counseling and genetic testing without IHC testing. A strategy of IHC testing for MMR protein expression in all patients with endometrial cancer and an FDR with any Lynch syndrome–associated cancer was reported to be cost-effective in the detection of Lynch syndrome.[340] This strategy had an incremental cost ratio of $9,126 per life-year gained relative to the least-costly strategy, which was genetic testing on all women diagnosed with endometrial cancer before age 50 years with at least one FDR with a Lynch syndrome–related cancer. Life expectancy was highest with the most inclusive testing strategy of IHC testing of all women with endometrial cancer irrespective of age at diagnosis or family history but had the least favorable incremental cost ratio of $648,494 per life-year gained. NCCN recommends tumor testing with IHC and/or MSI and a comprehensive tumor NGS panel testing for all endometrial cancers.[123] Despite these recommendations, the uptake of universal screening in women newly diagnosed with endometrial cancer is unclear.

(Refer to the PDQ summary on Genetics of Breast and Gynecologic Cancers for more information about endometrial cancer as a component of Lynch syndrome.)

###### MSI in all cancers

Use of MSI testing across all tumor types has become an important screening tool to select cases that may have a favorable response to immune checkpoint inhibitor therapy. These results may potentially be used to screen for Lynch syndrome in tumors other than CRC. A study evaluated MSI across a wide variety of malignancies and evaluated its use as a potential means to identify Lynch syndrome, regardless of tumor type.[341] In a study of more than 15,000 patients with more than 50 types of cancers evaluated in a single-center study, data on well-annotated tumor and matched normal DNA sequencing results with paired germline MMR gene testing, were used to determine MSI status. MSI was determined using a software tool that reports the percentage of unstable microsatellites as a score from paired tumor-normal genome sequencing data and allows for comprehensive investigation of MSI sites simultaneously. The approach used has been reported to be more sensitive across cancers not typically screened for MMR-deficiency (dMMR) than MSI testing of five mononucleotide microsatellite foci using PCR.[342] CRC and endometrial cancer comprised the majority of cancers with MSI-H in this study, but 38% (125 of 326) of MSI-H tumors and more than 90% of those with intermediate-level MSI were other cancer types. Germline testing confirmed a diagnosis of Lynch syndrome in 16.3% and 1.9% of tumors with MSI-H and intermediate-level MSI, respectively, in addition to 0.3% of cases that lacked MSI. Importantly, half of all Lynch syndrome carriers with MSI-H/intermediate tumors had primary cancers other than CRC or endometrial cancer, with many malignancies not associated with Lynch syndrome. Among those individuals with a noncanonical Lynch syndrome cancer, nearly half failed to meet clinical criteria for Lynch syndrome testing on the basis of their cancer diagnosis or family cancer history. Furthermore, intermediate-level MSI and MSS phenotypes were most often observed in cancers not classically related to Lynch syndrome and in individuals with germline PMS2 variants. This study supports other findings related to the variable phenotypic expression of Lynch syndrome on the basis of the altered MMR gene and its broad constellation of associated malignancies that make it difficult to be identified by clinical criteria alone. In addition, the investigators further analyzed a unique gene variant signature in every tumor and correlated results to the observed MSI phenotype and germline MMR status to provide some indirect data on whether a gene variant carrier’s cancer was caused by Lynch syndrome and MMR deficiency or possibly an incidental finding. This is pertinent in evaluating those cancers whose association with Lynch syndrome is unclear and debatable, such as breast and prostate cancer. The authors’ finding that none of the breast cancer patients with Lynch syndrome in this very large cohort had tumors with MSI lends support to the hypothesis that these individuals’ germline MMR gene variants may simply be incidental findings and not etiologic to their cancer diagnosis.

A single-institution study of 100 histologically confirmed small bowel adenocarcinomas with MSI/MMR tumor studies identified 26 cases with MMR deficiency, 10 of which were due to Lynch syndrome. Most cancers were located in the duodenum, followed by the jejunum and the ileum. The authors recommended that individuals with small bowel adenocarcinomas be screened for Lynch syndrome, given the implications of MMR deficiency on treatment and clinical management.[343]

###### Germline genetic testing

Genetic testing for germline pathogenic variants in MLH1, MSH2, MSH6, PMS2, and EPCAM can help formulate appropriate intervention strategies for the affected variant-positive individual and at-risk family members, many of whom may be unaffected by cancer.

If a pathogenic variant is identified in an affected person, then testing for that same pathogenic variant should be offered to all at-risk family members. At-risk relatives who test negative for the identified pathogenic variant in the family are not at increased risk of CRC or other Lynch syndrome–associated malignancies and can follow surveillance recommendations applicable to the general population. Family members who carry the familial pathogenic variant are referred to surveillance and management guidelines for Lynch syndrome. (Refer to the Management of Lynch syndrome section of this summary for more information.)

If no pathogenic variant is identified in the affected family member, then testing is considered negative for Lynch syndrome in that individual. With advances made in DNA sequencing technologies, it is unlikely that current gene testing is not sensitive enough to detect a pathogenic variant in the genes tested. Advances in testing, including the common use of NGS by most commercial testing laboratories have improved upon the detection of certain alterations such as large deletions or genomic rearrangements as well as the presence of a pseudogene PMSCL in PMS2.

Possible reasons why a pathogenic variant may not be detected include the following:

- The family could have a variant in a yet-unidentified gene that causes Lynch syndrome or a predisposition to colon cancer.
- The individual tested in the family may have developed colon cancer through a nongenetic mechanism (i.e., it is a sporadic case also known as a phenocopy), while the other cases in the family are really the result of a germline variant. If this scenario is suspected, testing another affected individual who has had a Lynch syndrome–associated cancer is recommended.
- In cases in which a CRC tumor displayed MSI and/or abnormal IHC, but no germline pathogenic variant was detected, biallelic somatic variants may be the resulting etiology. These are sometimes, confusingly, called Lynch-like syndrome cases, even though they are typically not considered to be familial.

Failure to detect a pathogenic variant could mean that the family truly is not at genetic risk despite a clinical presentation that suggests a genetic basis (e.g., the patient may have biallelic somatic variants in an MMR gene). If no variant can be identified in an affected family member, testing should not be offered to at-risk members because results would be uninformative for the relatives. They would remain at increased risk of CRC by virtue of their family history and should continue with recommended intensive screening.

(Refer to the Management of Lynch syndrome section of this summary for more information.)

###### Multigene (panel) testing

Germline variant analysis of MLH1, MSH2 (including EPCAM), MSH6, and PMS2 may be considered in instances in which tumor tissue is not available from individuals to test for MSI and/or MMR protein IHC. This approach has become less expensive with the advent of multigene (panel) testing, which is now offered by several clinical laboratories at a cost that may be comparable to single-gene testing. The cost of multigene testing may also approach the cost of tumor screening and may prove to be a cost-effective approach in individuals affected by CRC. At present, multigene tests are not routinely recommended for universal screening for Lynch syndrome among all newly diagnosed CRC patients, but they may be very useful in select populations, such as those with early-onset CRC [344] or from familial, high-risk clinic-based populations. It is also important to note that pathogenic variants may be detected in other cancer-associated genes beyond Lynch syndrome. In a study of 1,112 individuals who met NCCN criteria for Lynch syndrome testing and who underwent multigene testing with a 25-gene panel, as expected, 114 individuals (9.0%) were found to have pathogenic variants in MMR genes; however, 71 individuals (5.6%) were found to have a pathogenic variant in non-Lynch syndrome cancer predisposition genes, such as BRCA1, BRCA2, APC, MUTYH (biallelic), and STK11. Lastly, multigene tests yield a high proportion of VUS. In the aforementioned study, a total of 479 patients (38%) had one or more VUS.[345]

Individuals with early-onset CRC have been shown to have a high frequency and wide spectrum of germline pathogenic variants, indicating that panel testing in this population may be beneficial. In a study of 450 patients with early-onset CRC (mean age at diagnosis, 42.5 y) and a family history including at least one FDR with colon, endometrial, breast, ovarian, and/or pancreatic cancer, 75 germline pathogenic or likely pathogenic variants were identified in 72 patients (16%).[344] The spectrum of variants identified included Lynch syndrome and non-Lynch syndrome–associated genes, including several genes that have not traditionally been associated with CRC (e.g., BRCA1/BRCA2, ATM, CHEK2, PALB2, and CDKN2A). Given the high frequency and variety of hereditary cancer syndromes identified, the authors suggested that multigene testing in this population may be warranted. Similarly, another smaller single-institution analysis of 151 individuals with CRC identified pathogenic germline variants in 9.9% of individuals.[346]

Multigene testing has also been examined in a larger study of 1,058 individuals with CRC who were unselected for age at diagnosis, personal or family history, or MSI/MMR test results.[347] Germline pathogenic variants in cancer susceptibility genes were identified in 105 individuals (9.9%). While 33 individuals (3.1%) carried pathogenic variants in Lynch syndrome genes, 74 (7.0%) had pathogenic variants in non-Lynch syndrome–associated genes, including APC, MUTYH, BRCA1/BRCA2, PALB2, CDKN2A, TP53, and CHEK2. These data illustrate the breadth of variants that may be identified in unselected CRC patients; thus, use of a comprehensive multigene test may be warranted.

A 2017 study examined the frequency of pathogenic Lynch syndrome–associated gene variants in individuals undergoing multigene testing at a single commercial United States laboratory between 2012 and 2015, and reported on the characteristics of those carriers identified with Lynch syndrome.[348] The study reports on the largest cohort of individuals tested through multigene testing to date; data was reported on 34,980 individuals who had undergone various multigene panel tests that included the MMR and EPCAM genes, where the indication for testing was not limited to Lynch syndrome. A total of 618 pathogenic variants were identified in 612 individuals (1.7%) and analyses were conducted on 579 subjects (after exclusion of 33 individuals who had a Lynch syndrome–associated variant and a second MMR variant or other pathogenic alteration in another cancer predisposition gene). The majority of carriers were affected by cancer, including non-Lynch syndrome–associated malignancies, where breast cancer was most frequently reported (124/423, 23.5%). MSH6 variants were most prevalent (29.3%), followed by PMS2 (24.2%), MSH2 (23.7%), MLH1 (21.6%), and EPCAM (1.2%). This finding differs from previous data where MSH2 and MLH1 variants were more prevalent, as individuals were more often selected for Lynch syndrome–specific testing due to a personal and/or family history of CRC.

The study reports on genotype-phenotype correlations on 528 Lynch syndrome carriers, the majority of whom had CRC (186, 35.2%) and endometrial cancer (136, 25.8%), followed by breast cancer (124, 23.5%) and ovarian cancer (74, 14%).[348] One hundred forty-five carriers presented with breast or ovarian cancer as their sentinel tumor and did not carry a prior diagnosis of CRC or endometrial cancer prior to the time of multigene testing. When examining MMR gene variant distribution among tumor-specific subgroups, a higher frequency of MSH6 and PMS2 variants were detected in carriers with breast cancer only than MLH1 and MSH2, where the latter pathogenic variants were more frequent in subjects with CRC only. For patients with breast cancer only, the frequency of PMS2 gene variants was significantly higher than population estimates, which was not the case for MLH1, MSH2, or MSH6. A comparable retrospective study reported similar findings. Standardized incidence ratios (SIRs) of breast cancer were calculated by comparing observed breast cancer frequencies in a population of 423 women with pathogenic or likely pathogenic variants in MMR genes with those in the general population. The authors reported a statistically significant age-standardized risk of breast cancer for MSH6 carriers (SIR, 2.11; 95% CI, 1.56–2.86) and PMS2 carriers (SIR, 2.92; 95% CI, 2.17–3.92).[349] A critical limitation of both of these studies was the excess of breast cancer cases in the overall referral population as well as the known high background population prevalence of MSH6 and PMS2 germline pathogenic variants.

Clinical criteria for the identification of Lynch syndrome, including the Amsterdam criteria, revised Bethesda guidelines, or the PREMM(1,2,6) risk prediction model, would have failed to identify 27.3% of Lynch syndrome carriers in this study.[348] Given the increased prevalence of breast and ovarian cancers, 58.9% met the NCCN guidelines for BRCA1/BRCA2 testing and of these, 36.7% also met NCCN guidelines for Lynch syndrome testing. Lastly, there were limited data on tumor testing results, available only on 18.8% of pathogenic variant carriers, where results were often discordant with the altered gene, which was most often reported in MSH6 and PMS2 carriers. Results of this study support the use of multigene testing for Lynch syndrome and further study of the respective cancer risks, as current testing strategies limit identification of Lynch syndrome carriers and associated malignancies.

Lastly, germline MMR genes have been detected unexpectedly among individuals undergoing multigene testing for cancers not commonly associated with Lynch syndrome, such as breast and prostate cancer. As a result, the cancer spectrum associated with Lynch syndrome may be wider than previously appreciated. For more information, see the Breast cancer and Prostate cancer sections and Genetics of Prostate Cancer.

(Refer to the Multigene [panel] testing section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for more information about multigene testing, including genetic education and counseling considerations, and research examining the use of multigene testing.)

###### Cost-effectiveness of multigene (panel) testing

As genetic testing becomes routine rather than the exception, questions regarding the cost of testing are inevitable. Historically, a cost-effectiveness ratio of $50,000 per quality-adjusted life-year (QALY) has been used as the benchmark for good value for care.[350] Over time it has been suggested that this threshold is too low and that other thresholds such as $100,000 or $150,000 be used.[350]

A 2015 study evaluated the cost-effectiveness of multigene testing for CRC and polyposis syndromes in patients referred to a cancer genetics clinic.[351] These authors developed a decision model to estimate the immediate and downstream costs for patients referred for evaluation and of CRC surveillance in family members identified as carriers of pathogenic variants. The costs were estimated on the basis of published models from the CDC and from an academic molecular genetics laboratory. They classified the syndromes on the basis of inheritance pattern and penetrance of CRC. Four custom panels were compared with the standard of care. The four panels tested for (1) Lynch syndrome–associated genes only (MLH1, MSH2, MSH6, PMS2, and EPCAM); (2) genes in panel 1 and additional genes associated with autosomal dominant inheritance and high CRC penetrance (APC, BMPR1A, SMAD4, and STK11); (3) genes in panels 1 and 2 and those associated with autosomal recessive inheritance with high CRC penetrance (MUTYH); or (4) all genes in the first three panels and those associated with autosomal dominant conditions with low penetrance (PTEN, TP53, CDH1, GALNT12, POLE, POLD1, GREM1, AKT1, and PIK3CA). The respective costs were as follows: panel 1, $144,235 per QALY; panel 2, $37,467 per QALY; panel 3, $36,500 per QALY; and panel 4, $77,300 per QALY when compared with panel 3. The authors concluded that the use of an NGS multigene test that includes highly penetrant CRC and polyposis syndromes and Lynch syndrome cancer genes was the approach most likely to provide clinically meaningful results in a cost-effective fashion.

The cost of germline genetic testing continues to decrease with advancements in technology since the time this model analysis was conducted; additional studies are needed to continue to assess the cost-effectiveness of this testing approach.

#### Prevalence, clinical manifestations, and cancer risks associated with Lynch syndrome

Lynch syndrome is an autosomal dominant syndrome characterized by an early age of onset of CRC, excess synchronous and metachronous colorectal neoplasms, right-sided predominance, and extracolonic tumors, notably endometrial cancer. Lynch syndrome is caused by pathogenic variants in the DNA MMR genes, namely MLH1 on chromosome 3p21;[352,353] MSH2 on chromosome 2p22-21;[354,355] MSH6 on chromosome 2p16;[356] and PMS2 on chromosome 7p22.[352-355,357-360] The function of these genes is to maintain the fidelity of DNA during replication. Lynch syndrome is also associated with pathogenic variants of the EPCAM gene on chromosome 2p21, which causes epigenetic silencing of MSH2, located immediately downstream of this gene.[361,362]

Lynch syndrome accounts for about 3% of all newly diagnosed cases of CRC.[309] In earlier studies, the average age of CRC diagnosis in Lynch syndrome pathogenic variant carriers was as young as 44 to 52 years. [256,309,363] In contrast, from 2015 to 2019, the median age of CRC diagnosis was 66 years in individuals with sporadic CRC.[364] In subsequent studies that corrected for ascertainment bias to determine cancer-related risk estimates and genotype-phenotype correlations, the average age at CRC diagnosis was 61 years among Lynch syndrome–associated pathogenic variant carriers.[365]

Original reports related to overall and gene-specific prevalence estimates in Lynch syndrome relied heavily on retrospective data from familial cancer registries worldwide. Earlier risk estimates of CRC (and endometrial cancer) reported in Lynch syndrome were subject to ascertainment bias and overestimation, given that data were derived largely from familial cancer registries and cases were often ascertained based on young-onset CRC or an increased number of CRC cases among relatives. Correction of these cancer risk estimates has been made possible through modified segregation analyses, where statistical methodology provides more accurate estimates and adjusts for ascertainment bias. Conversely, risk estimates related to extracolonic malignancies, with the exception of endometrial cancer, may be prone to underestimation because many families may have underreported these cancers in relatives, and Lynch syndrome–related tumors may have occurred later in life.

In a large population-based study of 5,744 CRC cases who were recruited irrespective of family cancer history from the United States, Australia, and Canada, it was estimated that 1 in 279 individuals in the population carry an MMR pathogenic variant associated with Lynch syndrome.[366]

In another population-based study of 450 individuals with CRC but limited to young onset with diagnoses occurring before age 50 years, germline pathogenic variants were identified in 72 of 450 individuals (16%), as detected by multigene (panel) testing for inherited cancer susceptibility genes. As expected, the majority of identified variants were in genes known to be associated with CRC, predominantly Lynch syndrome (37 of 72 patients, 51.4%). However, 13 of 72 patients (18.1%) had pathogenic variants in genes not traditionally associated with CRC, including but not limited to BRCA1/BRCA2, which accounted for 8% of the identified variants. Because of the high frequency and wide variety of pathogenic variants identified, the authors suggested consideration of multigene testing for all individuals with early-onset CRC.[344]

##### Gene-specific considerations and associated CRC risk

The MLH1 and MSH2 genes were originally thought to account for most pathogenic variants of the MMR genes found in Lynch syndrome. However, the prevalence of MSH6 and PMS2 pathogenic variants has been increasing with improved DNA analyses and universal tumor screening of all CRCs.[366] MSH6 and PMS2 variants may be more common in unselected cases of CRC (and endometrial cancer),[366] compared with MLH1 and MSH2 variants which were more commonly identified in individuals from high-risk CRC clinics.[367,368]

###### MLH1

In early studies, the prevalence of MLH1 pathogenic variants in individuals with Lynch syndrome was reported to be between 41.7% [369] and 50%,[370] making MLH1 the most commonly altered MMR gene in Lynch syndrome families. It was not until a report on the population-based prevalence of Lynch syndrome that the MLH1 pathogenic variant was estimated to be 1 in 1,946, ranking third after PMS2 (1 in 714) and MSH6 (1 in 758), as estimated in a large international study of 5,744 CRC cases.[366]

MLH1 pathogenic variants are associated with the entire spectrum of malignancies associated with Lynch syndrome.[370] The lifetime risk of any Lynch syndrome–associated cancer by age 70 years has been found to range between 59% and 65% in MLH1 pathogenic variant carriers.[285] The highest risk among carriers of pathogenic MLH1 variants is for CRC, which is estimated to be between 41% and 68%,[3,4,365] and the mean age at diagnosis of CRC was 42.8 years (range, 16–81 y) in one study that included 137 affected individuals.[371] In a more recent prospective study using pooled European registry data of 944 MLH1 carriers without cancer, the cumulative CRC incidence was 46% at age 70 years, despite colonoscopic surveillance (albeit at various intervals).[5]

Unlike the APC gene of FAP, in which several phenotypes of differing severity and spectrum of disease occur, genotype-phenotype relationships have been elusive in the MMR genes. In a large series of MLH1 pathogenic variant carriers, women with truncating MLH1 pathogenic variants had significantly later onset of endometrial cancer than did those with nontruncating variants.[372] A nonsignificant trend toward later CRC onset in those with truncating MLH1 pathogenic variants was also identified. As no other correlations were found with specific types of variants in MLH1 or other MMR genes, these associations could be artifactual and warrant further validation.

###### MSH2

The prevalence of MSH2 pathogenic variants in individuals or families with Lynch syndrome has varied across studies. MSH2 pathogenic variants were reported in 38% to 54% of Lynch syndrome families in studies including large cancer registries and among cohorts of early-onset CRC (younger than age 55 y).[258,373] The reported prevalence of MSH2 pathogenic variants was 32.8% in 2012 in the database of the International Society for Gastrointestinal Hereditary Tumors (InSiGHT), a large professional organization devoted to the collaborative study of familial GI cancer,[369] with families readily ascertained based on the presence of extracolonic cancers in MSH2-associated Lynch syndrome. However, the prevalence of MSH2 pathogenic variants was estimated to be 1 in 2,841 in a population-based cohort of 5,744 CRC cases recruited from the United States, Australia, and Canada;[366] MSH2 was the least prevalent of the MMR gene variants associated with Lynch syndrome.

The risk of any Lynch syndrome–associated cancer by age 70 years has been found to range between 57% to nearly 80% in MSH2 pathogenic variant carriers.[285] The lifetime risk of colon cancer associated with MSH2 pathogenic variants is estimated to be between 48% and 68%.[3,4,365] In a case series of Lynch syndrome patients, those carrying germline MSH2 pathogenic variants (49 individuals, 45% women) had a lifetime (cutoff age, 60 y) risk of extracolonic cancers of 48% compared with 11% for MLH1 carriers (56 individuals, 50% women).[374] In a more recent prospective study using pooled European registry data of 616 MSH2 carriers without cancer, the cumulative CRC incidence was 35% at age 70 years, despite colonoscopic surveillance.[5]

The mean age at diagnosis of CRC in MSH2 carriers has been comparable to MLH1 carriers. One study that included 143 affected individuals with MSH2 pathogenic variants found a mean age at CRC diagnosis of 43.9 years (range, 16–90 y). The same study reported a mean age at CRC diagnosis of 42.8 years (range, 16–81 y) in 137 MLH1 pathogenic variant carriers.[371]

###### MSH6

Most series have reported a prevalence of germline MSH6 pathogenic variants in approximately 10% of Lynch syndrome families from high-risk clinics and a higher proportion of unselected CRC patients, at approximately 50%.[356,375-380] The reported prevalence of MSH6 pathogenic variants in the InSiGHT database was 18% in 2012.[369] The wide range of prevalence estimates for pathogenic MSH6 variants was a result of small sample sizes, ascertainment bias, and the later age of CRC onset and less striking family histories in MSH6-associated Lynch syndrome families compared with MLH1- and MSH2-associated Lynch syndrome families.[375] This is in line with findings from a population-based study of 42 carriers of deleterious MSH6 germline pathogenic variants, 30 (71%) of whom had a family cancer history that did not meet the Amsterdam II criteria.[6] In a recent, international, population-based study of 5,744 CRC cases, the prevalence of MSH6 pathogenic variants was estimated to be 1 in 758, ranking as the second most prevalent of the MMR genes following PMS2.[366]

The lifetime risk of any Lynch syndrome–associated cancer among MSH6 pathogenic variant carriers is approximately 25% [285] with CRC lifetime risk estimated to be between 12% and 22% [4,6] with MSH6 carriers diagnosed with CRC at a later age than MLH1 and MSH2 carriers. In an earlier study of 146 MSH6 carriers (59 men and 87 women) from 20 families, all of whom had truncating pathogenic variants in MSH6, there was a similar prevalence of CRC by age 70 years among MLH1, MSH2, and MSH6 carriers (P = .0854). However, the mean age at diagnosis for colorectal carcinoma was (a) 55 years for male MSH6 carriers (n = 21; range, 26–84 y) versus 43 years and 44 years in carriers of MLH1 and MSH2 pathogenic variants, respectively; and (b) 57 years for female MSH6 carriers (n = 15; range, 41–81 y) versus 43 years and 44 years in carriers of MLH1 and MSH2 pathogenic variants, respectively.[381]

The largest series of carriers of MSH6 pathogenic variants reported to date includes 113 families from five countries who were ascertained through family cancer clinics and population-based cancer registries.[6] Compared with the incidence for the general population, MSH6 pathogenic variant carriers had an eightfold increased incidence of CRC (HR, 7.6; 95% CI, 5.4–10.8), which was independent of sex and age. By age 70 years, 22% (95% CI, 14%–32%) of male carriers of MSH6 pathogenic variants developed CRC compared with 10% (95% CI, 5%–17%) of female carriers. By age 80 years, the CRC prevalence doubled to 44% (95% CI, 28%–62%) of male carriers of MSH6 pathogenic variants diagnosed with CRC compared with 20% (95% CI, 11%–35%) among female carriers.

In a more recent prospective study using pooled European registry data of 305 MSH6 carriers without cancer, the cumulative CRC incidence was 20% at age 70 years despite colonoscopic surveillance.[5]

###### PMS2

PMS2 was the last of the genes in the MMR family of genes to be identified. This was because lower penetrance among families made it more difficult to identify [382] using clinical criteria, and also because of limitations of DNA mutational analysis that result from pseudogene interference.

In earlier studies of individuals with CRC and suspected Lynch syndrome, the prevalence of PMS2 pathogenic variants was variable from 2.2% to 5%,[256,383] with an increase to 7.5% as reported in the InSiGHT database in 2012.[369] From a study examining universal tumor testing results from unselected cases of CRC in Switzerland, IHC evaluation of 1,000 consecutive cases found isolated absence of PMS2 expression in 1.5% of all tumors. If this frequency of PMS2-deficient CRCs were representative of all PMS2-associated Lynch syndrome, PMS2 would be the most common gene associated with Lynch syndrome.[384] Results from a large, population-based CRC cohort found that the prevalence of PMS2 pathogenic variants was the highest among all MMR variants, in which 1 person in 714 carried a pathogenic PMS2 gene variant.[366]

The lifetime risk of any cancer has been found to range between 25% and 32% for heterozygous PMS2 pathogenic variant carriers.[285] A meta-analysis of three population-based studies and one clinic-based study estimated that for carriers of PMS2 pathogenic variants, the risk of CRC to age 70 years was 20% among men and 15% among women, and the risk of endometrial cancer was 15%.[385] Similarly, a European consortium of clinic-based registries, taking care to correct for ascertainment bias, found a cumulative lifetime (to age 70 y) CRC risk of only 19% in men and 11% in women with PMS2 pathogenic variants.[386] In addition, patients with PMS2 pathogenic variants presented with CRC 7 to 8 years later than did those with MLH1 and MSH2 pathogenic variants.[383] In a prospective study using pooled European registry data of 77 PMS2 carriers without cancer, the cumulative CRC incidence was 10% at age 70 years despite colonoscopic surveillance.[5] An analysis of nearly 5,000 patients from 284 PMS2 families from the European consortium, supplemented by data from two more registries, was intended to provide more robust PMS2-associated cancer risk estimates.[387] The risk of CRC up to age 80 years was 13% (95% CI, 7.9%–22%) for men and 12% (95% CI, 6.7%–21%) for women, compared with general population risk estimates of 6.6% and 4.7%, respectively. Endometrial cancer risk was found to be 13% (95% CI, 7%–24%). No excess risk of other Lynch syndrome–spectrum tumors was identified in these cohorts. The authors concluded that these data justify consideration of delaying initiation of colonoscopy until age 35 to 40 years, and with longer follow-up intervals (2–3 y), although this was not specifically studied. As with the original reports from the European Prospective Lynch Syndrome Database, it was not possible to assess the extent to which such colonoscopies and polypectomies might have reduced the rate of detected CRCs.

The PLSD is a major ongoing initiative to assess cancer risks in Lynch syndrome. Although it lacks specific details regarding screening practices, it includes outcome data from many European programs, classified by age, gender, and MMR gene.[5,388,389] Recognizing limitations in the larger PLSD, a subset with more detailed surveillance data has been provided.[390] These prospective colonoscopy data from Germany, Holland, and Finland included 2,747 patients of whom 62 had no prior cancer at surveillance initiation. Because of differences in surveillance practices, the colonoscopy interval approximated 1 year in Germany, 2 years in Holland, and 3 years in Finland. The median number of colonoscopies was five and the median per-patient observation time was approximately 8 years. Despite the differences in surveillance intervals, similar adenoma detection rates were found in those patients with a history of cancer (14%) and those without (15.6%). At 10 years of follow-up, rates of first cancer were 8.4% and 14% for metachronous tumors. Factors increasing risk were male sex, prior CRC, presence of MLH1 or MSH2 pathogenic variants, age older than 40 years, and adenoma at index colonoscopy. Notably, no significant difference in CRC detection or in stage at detection was noted between screening intervals of 1, 2, or 3 years.

It is important to note that a more severe phenotype is seen among carriers of biallelic PMS2 pathogenic variants. For more information, see the IHC in constitutional mismatch repair deficiency (CMMRD) syndrome section.

The lifetime risk of CRC and endometrial cancer in carriers of these pathogenic variants is summarized in Table 11.

Table 11. Lifetime Risk of Colorectal and Endometrial Cancers in Carriers of Lynch Syndrome–Associated Pathogenic Variants

Gene | Lifetime Risk of Colorectal Cancer (%) | Lifetime Risk of Endometrial Cancer (%) | References
MLH1 | 41–50 | 34–54 | [3 - 5]
MSH2 | 35–56 | 21–51 | [3 - 5]
MSH6 | 10–22 | 16–49 | [4 - 6]
PMS2 | 10 | 24 | [5]

###### EPCAM

A subset of individuals with Lynch syndrome (approximately 1%) have a pathogenic variant in EPCAM, which leads to hypermethylation and inactivation of the MSH2 promoter.[391] In a European study of 194 EPCAM deletion carriers, the cumulative risk of CRC up to age 70 years was 75% with the average age at onset of 43 years. This is comparable to the risk in MSH2 carriers (up to 68% by age 70 y). However, the risk of endometrial cancer among women with an EPCAM deletion was only 12% in this study, compared with a risk of up to 71% in MSH2 carriers.[392] The associated phenotype is dependent on the location of the deletion variant in the 3’ end of the EPCAM gene; if the deletion is large and includes parts of the promoter of MSH2, the phenotype will be similar to other MSH2-associated Lynch syndrome families.[392] When the deletion involves the termination signal of EPCAM but spares all of the MSH2 gene and promoter, the phenotype is mainly confined to CRC.[393]

One study of two families with the same EPCAM deletion limited to the 3’ end of the gene and not extending into the promoter of MSH2 found few extracolonic cancers and no endometrial cancers.[393] However, a subsequent study demonstrated that women with MSH2 protein expression loss caused by EPCAM variants are also at risk of endometrial cancer.[392]

###### Intragenic variability in CRC penetrance among carriers of MMR pathogenic variants

While it is known that MMR pathogenic variant carriers have high lifetime risks of CRC, estimates of these risks vary considerably between studies. Additional factors, including ascertainment bias, heritable modifiers of risk, and nonheritable risk factors may contribute substantially to variation in lifetime risk estimates.

A study from the Colon Cancer Family Registry reported that, depending on the gene that has the pathogenic variant and an individual's sex, 16% to 23% of MLH1 and MSH2 carriers had lifetime CRC risks of less than 10% (i.e., their risks approached average risk for the general population).[394] Conversely, 10% to 17% of carriers had lifetime risks of more than 90% (i.e., these carriers were almost certain to develop CRC).

An international registry–based study used retrospective data to examine variation in CRC risk in 5,255 families with Lynch syndrome.[395] The study used a segregation analysis conditioned on ascertainment to estimate mean CRC penetrance and modeled unmeasured polygenic factors to estimate variations in penetrance. Nearly 80,000 individuals were included in the study. The number of patients with EPCAM pathogenic variants was insufficient to include in the analysis. Therefore, only families with MLH1, MSH2, MSH6 and PMS2 pathogenic variants were included. Patients were clustered by continent (North America, Europe, and Australasia). There was strong evidence that unknown familial risk factors modified CRC risk for Lynch syndrome carriers across all continents. This resulted in wide variation in CRC risk for each MMR gene. This variation was most pronounced for MLH1 and MSH2, in which 7% to 56% of carriers had a CRC penetrance of less than 20%, 9% to 44% of carriers had a CRC penetrance of more than 80%, and only 10% to 19% of carriers had a CRC penetrance of 40% to 60%. Wide variation in CRC risk was observed even when the analysis was restricted to the 250 families carrying the most common variant in the dataset (the MSH2 pathogenic c.942+3A>T variant). In this MSH2 cohort, 9% to 15% of carriers had a CRC penetrance of less than 20%, and 33% to 45% of carriers had a CRC penetrance of more than 80%. Limitations of the study included the following: (1) 94% of patients were ascertained from high-risk clinics, (2) there were limited data on screening and polypectomy, and (3) multiple assumptions and models were used. These results suggest that published mean cancer risks may not be representative for most Lynch syndrome carriers. Therefore, the authors suggested that current screening guidelines might not be applicable to large proportions of Lynch syndrome patients. Until additional studies have identified and characterized genetic and environmental risk modifiers, contemporary guidelines are recommended for most Lynch syndrome carriers.

###### CMMRD

As described above, patients may carry MMR gene variants in both parental alleles, in a condition known as CMMRD. For more information, see the IHC in constitutional mismatch repair deficiency (CMMRD) syndrome section.

The occurrence of such biallelic variants is associated with a characteristic but not diagnostic clinical phenotype. Clinical features include hematologic malignancies and brain tumors in children. When GI tumors occur, the age of onset is strikingly low, sometimes before age 20 years. Café au lait spots and features otherwise suggesting neurofibromatosis are characteristic. Occasionally, patients present with multiple adenomas.

###### Ethnic variation and founder pathogenic variants in Lynch syndrome

The frequency of MMR variants does not differ markedly from population to population, with similar frequencies identified in a host of different countries. As with hereditary breast and ovarian cancer (HBOC), there are certain variants that occur at higher frequencies within a particular ethnic group. Notable in HBOC are the commonly recurring Ashkenazi Jewish variants, so common that direct-to-consumer testing is offered for these common variants. (Refer to the Prevalence of BRCA1/2 Pathogenic Variants section in BRCA1 and BRCA2: Cancer Risks and Management and the Direct-to-Consumer [DTC] Genetic Tests section in Cancer Genetics Risk Assessment and Counseling for more information.) The ancientness of apparent founder variants is generally established by haplotype analysis. In some instances, what may appear to be a founder variant is simply a frequently recurring de novo variant.[396]

Among the first population findings regarding the MMR genes of Lynch syndrome was the recognition of two very common MLH1 variants in Finland, accounting for most cases of Lynch syndrome in this country.[397,398] Since that time, founder variants have been identified in most populations in which relatively unselected series of patients with CRC have undergone variant testing. Many of the reports originate in Europe. As in Finland, these may be straightforward to identify in the setting of fairly homogeneous ethnicity with low immigration. Founder variants in Europe have been found in the United Kingdom, Sweden, Switzerland, Italy,[399] Portugal, France, Spain, and Hungary, and are likely present in all ethnic groups. Fewer such reports have come from Asia,[400] Latin America, the Middle East, and Africa.

In the United States, a deletion in exons 1–6 of the MSH2 gene has been estimated to account for as much as 20% of variants in that gene. This so-called American Founder Mutation has been determined by haplotype analysis to date back about 500 years.[401]

A South American study combining data from Uruguay, Colombia, Brazil, Argentina, and Chile also selected cases of interest according to Amsterdam and Bethesda features, yielding a 60% frequency of MLH1 and 40% frequency of MSH2. MSH6 and PMS2 were not evaluated. Selection bias likely influenced the frequency of variants and perhaps the relative contributions by MLH1 and MSH2. A possible founder variant in Colombia was noted.[402]

Although testing for commonly recurring founder variants in a given ethnic/geographic area has been considered to be a cost-effective first step when a stepwise strategy is employed, it is likely not necessary when the increasingly common approach of broad panel testing is undertaken as a basic strategy.

Some ethnic groups have increased rates of consanguinity and a subsequent risk of CMMRD. For more information, see the IHC in constitutional mismatch repair deficiency (CMMRD) syndrome section.

###### Ethnic variation in the United States

In this section, the data exploring the distribution of MMR gene variants amongst differing ethnic groups in the United States are presented. The interpretation of these studies is challenging given the presence of selection and ascertainment bias. In addition, even population-based studies are limited by small sample sizes for many ethnic groups and self-reporting of ethnicity/race.

There are few data suggesting the presence of much variation in Lynch syndrome frequency according to geography or ethnicity. Within a small and/or homogeneous ethnic group the presence of founder variants may seem to increase the prevalence of variants in that particular gene. Slight differences in the proportion of MLH1 and MSH2 variants exist from one population to another. MSH6 and PMS2 have been insufficiently studied at the population level as to enable inferences about their relative frequencies.

The most representative population-based studies in the United States, such as that in Columbus, Ohio, have been overrepresented by White individuals, in accordance with their greater overall numbers. Consequently, data on racial and ethnic minorities such as Hispanic and African American individuals suffer from smaller and less rigorously representative samples.

A study conducted in Puerto Rico considered variants in 89 Caribbean Hispanic patients with Lynch syndrome suspected on the grounds of Amsterdam criteria or Bethesda guidelines.[403] Patients underwent either immediate germline testing or step-wise evaluation beginning with tumor MSI/IHC. Frequencies of variants by gene were 67% for MSH2, 25% for MLH1, and 8% for MSH6. No definite founder variants were evident. Clearly, the selection of participants according to clinical family history criteria would have led to an underreporting of the less penetrant MSH6 and PMS2 genes.

Clinic-based series from California, Texas, and Puerto Rico yielded an overall variant prevalence similar to those described, with somewhat more MLH1 than MSH2, but also including MSH6 and PMS2. Presence of potential founder variants traceable back to Spain and Europe were noted.[404]

The closest population-based information on Lynch syndrome in Hispanic individuals is a Southern California study based on the California Tumor Registry, in which 265 patients were identified.[405] Of those with MSI-H tumors, 13 (62%) had MMR variants. Frequencies of MMR variants were 46% for MLH1 (6 of 13), 31% for MSH2 (4 of 13), 15% for MSH6 (2 of 13), and 8% for PMS2 (1 of 13).

The problem of small numbers is highlighted by the findings from the more truly population-based studies that have been done in the United States. In a study from Columbus, Ohio, only 8% of the consecutive series patients were African American and the proportion of Hispanic individuals as a subset of White individuals was not stated.[344] In another study involving panel testing of nearly all CRC patients treated at Dana-Farber Cancer Institute, less than 5% were Black and less than 3% were Hispanic, underscoring the challenge of extracting meaningful data from small subsets.[347]

###### Lynch syndrome in African Americans

The issues in evaluating prevalence of Lynch syndrome and cancer risks associated with MMR variants in African American individuals are similar to those in Hispanic individuals: a heterogeneous population that has been understudied. A study of clinic-based data from 13 referral centers in the United States identified 51 families with Lynch syndrome with frequencies of MMR gene variants as follows: 61% MLH1, 21% MSH2, 6% MSH6, and 12% PMS2. Age of cancer onset distribution curves were very similar to those seen in White populations.[406] As with most of the studies in Hispanic individuals, cases were not identified according to any consistent, programmatic evaluation such as universal tumor testing.

##### Risk of metachronous CRC

A hallmark feature of Lynch syndrome is that carriers of pathogenic MMR gene variants have an increased risk of development of synchronous and metachronous colorectal neoplasms.[388,407,408] In one study of 382 individuals with Lynch syndrome from the Colon Cancer Family Registry, the incidence of metachronous CRCs was 16% at 10 years, 41% at 20 years, and 63% at 30 years after segmental colectomy.[407] The risk of metachronous CRC decreased in a stepwise fashion by 31% for every 10 cm of the colon that was removed, with none of the 50 individuals who had extensive colectomies diagnosed with metachronous CRC. Another prospective study of 1,273 patients with Lynch syndrome who had prior cancer reported a cumulative incidence of subsequent CRC of 46% for MLH1 carriers, 48% for MSH2 carriers, and 23% for MSH6 carriers. This represents only a slightly greater risk of new cancers than pathogenic variant carriers with no previous cancer diagnosis. Excellent survival was again seen and was regarded as a combination of favorable tumor pathology and the effect of surveillance.[388]

##### Risk of extracolonic malignancies associated with Lynch syndrome

Patients with Lynch syndrome are at an increased risk of other cancers, especially those of the endometrium. The cumulative risk of extracolonic cancer has been estimated to be 20% by age 70 years in 1,018 women in 86 families, compared with 3% in the general population.[409] There is some evidence that the rate of individual cancers varies from kindred to kindred.[410-412]

###### Endometrial cancer

The most common extracolonic malignancy in Lynch syndrome is endometrial adenocarcinoma, which affects at least one female member in about 50% of Lynch syndrome families. In addition, 50% of women with an MMR gene pathogenic variant will present with endometrial cancer as her first malignancy.[413]

The lifetime risk of endometrial cancer has been estimated to be from 44% in carriers of MLH1 pathogenic variants to 71% in carriers of MSH2 pathogenic variants, although some earlier studies may have overestimated risk due to ascertainment bias.[6,260,365,373,414] Lifetime risk of endometrial cancer in carriers of MSH6 pathogenic variants in 113 families was estimated to be 26% at age 70 years and 44% at age 80 years;[6] overall, female carriers of MSH6 pathogenic variants had an endometrial cancer risk that was 25 times higher than women in the general population (HR, 25.5; 95% CI, 16.8–38.7; P < .001).[6] In another study, the cumulative lifetime risk of uterine cancer was higher in MSH6 carriers (71%) than in carriers of MLH1 (27%) and MSH2 (40%) pathogenic variants (P = .02), with an older mean age at diagnosis of 54 years in carriers of MSH6 pathogenic variants (n = 29; range, 43–65 y) versus 48 years in carriers of MLH1 and 49 years in carriers of MSH2 pathogenic variants.[381] In carriers of PMS2 pathogenic variants, the endometrial cancer risk at age 70 years has been reported to be 15%.[385] Prospective data collected in the Colon Cancer Family Registry program yielded 5-year endometrial cancer risks of about 3% and 10-year endometrial cancer risks of about 10% among women with MMR gene pathogenic variants.[415] A prospective study using pooled European registry data of 1,942 MMR carriers without prior cancer reported a cumulative incidence of endometrial cancer of 34% in MLH1 carriers, 51% in MSH2 carriers, 49% in MSH6 carriers, and 24% in PMS2 carriers.[5] Women with loss of MSH2 protein expression caused by an EPCAM pathogenic variant are also at risk of endometrial cancer depending upon the location of the variant in EPCAM. One study found a 12% (95% CI, 0%–27%) cumulative risk of endometrial cancer in EPCAM deletion carriers.[392]

A study of 127 women with Lynch syndrome who had endometrial cancer as their index cancer were found to be at significantly increased risk of other cancers. The following elevated risks were reported: CRC, 48% (95% CI, 27.2%–58.3%); kidney, renal pelvis, and ureter cancer, 28% (95% CI, 11.9%–48.6%); urinary bladder cancer, 24.3% (95% CI, 8.56%–42.9%; and breast cancer, 2.51% (95% CI, 1.17%–4.14%).[416]

In a study of 113 families that carried MSH6 pathogenic variants from the Colon Cancer Family Registry, female MSH6 carriers had a 26-fold increased incidence of endometrial cancer (HR, 25.5; 95% CI, 16.8–38.7) compared with the general population. A sixfold increased incidence of other cancers associated with Lynch syndrome (HR, 6.0; 95% CI, 3.4–10.7) was observed compared with the general population, but not among male MSH6 carriers.[6]

Lynch syndrome–associated endometrial cancer is not limited to the endometrioid subtype, and the spectrum of uterine tumors in Lynch syndrome may include clear cell carcinoma, uterine papillary serous carcinoma, and malignant mixed Müllerian tumors.[417] Also, endometrial cancer most commonly arises from the lower uterine segment. (Refer to the Endometrial cancer screening in Lynch syndrome section of this summary for information about screening methods.)

###### Cancer risk in Lynch syndrome beyond CRC and endometrial cancer

Multiple studies demonstrate an increased risk of additional malignancies associated with Lynch syndrome, including cancers of the stomach, pancreas, ovary, small intestine, and brain, transitional cell carcinoma of the bladder, ureters, and renal pelvis, and sebaceous adenomas of the skin.[409,410,418-421] In addition, some studies have suggested an association with breast, prostate, and adrenal cortex cancers.[415,419,422-424] The strength of the association for many of these malignancies is limited by the majority of studies having a small sample size (and consequently, wide CIs associated with relative risk [RR]), the retrospective nature of the analyses, and referral or ascertainment bias.

The largest prospective study to date is of 446 unaffected carriers of pathogenic variants from the Colon Cancer Family Registry.[415] The Colon Cancer Family Registry is an international cohort with both population-based and clinic-based recruitment from six centers in North America and Australia. Control subjects were noncarriers from families with a known MMR pathogenic variant. Three subcohorts were used to analyze the risk of CRC (365 carriers, 903 noncarriers), endometrial cancer (215 carriers, 523 noncarriers), and other cancers (446 carriers, 1,029 noncarriers). Participants who were followed for up to 10 years demonstrated an increased SIR for CRC (SIR, 20.48; 95% CI, 11.71–33.27; P < .01), endometrial cancer (SIR, 30.62; 95% CI, 11.24–66.64; P < .001), ovarian cancer (SIR, 18.81; 95% CI, 3.88–54.95; P < .001), gastric cancer (SIR, 9.78; 95% CI, 1.18–35.30; P = .009), renal cancer (SIR, 11.22; 95% CI, 2.31–32.79; P < .001), bladder cancer (SIR, 9.51; 95% CI, 1.15–34.37; P = .009), pancreatic cancer (SIR, 10.68; 95% CI, 2.68–47.70; P = .001), and female breast cancer (SIR, 3.95; 95% CI, 1.59–8.13; P = .001).[415]

A well-described variant of Lynch syndrome whose phenotype includes multiple cutaneous neoplasms (including sebaceous adenomas, sebaceous carcinomas, and keratoacanthomas) and CRC is Muir-Torre syndrome.[425,426] Pathogenic variants in the MLH1, MSH2, and MSH6 genes have been found in Muir-Torre families with an increased prevalence described among MSH2 carriers.[427-434] A study of 1,914 unrelated MLH1 and MSH2 probands found MSH2 to be more common in individuals with the Muir-Torre syndrome phenotype. Of 15 individuals with sebaceous skin tumors, 13 (87%) had MSH2 pathogenic variants compared with two individuals who had MLH1 pathogenic variants (P = .05).[435] Evidence of defective DNA MMR activity using IHC or MSI testing was reported in 69 of 163 randomly collected sebaceous neoplasms (42%), suggesting that this is a common mechanism for the development of these lesions, and that testing for defective MMR in sebaceous neoplasms would be an ineffective means to screen for Lynch syndrome or Muir-Torre syndrome.[436] (Refer to the Sebaceous Carcinoma section in the PDQ summary on Genetics of Skin Cancer for more information about cutaneous neoplasms in Muir-Torre syndrome.)

Table 12. Lynch Syndrome–Associated Cancers and Cumulative Risk Up to Age 70 Years^a^

Cancer Site^b^ | General Population Risk (%)^c^ | Risk in Individuals With Lynch Syndrome (%)^d^ | References
Stomach | <1 | 0.2–13 | [4 ,6 ,371 ,439 - 444]
Ovary | 1.3 | 3.4–22 | [4 ,6 ,365 ,371 ,381 ,385 ,440 - 442 ,444 ,445]
Hepatobiliary tract | <1 | 0.02–4 | [4 ,442 ,444 - 446]
Urinary tract | <1 | 0.2–25.5 | [4 ,371 ,385 ,440 - 442 ,444 ,445 ,447]
Small bowel | <1 | 0.4–12 | [4 ,343 ,371 ,439 - 442]
Brain/CNS | <1 | 1.2–3.7 | [371 ,440 ,442 ,444]
Sebaceous neoplasms | <1 | 9.0 | [429 ,448 ,449]
Pancreas | 1.6 | 0.4–3.7 | [440 ,450 ,451]

CNS = central nervous system.

^a^Adapted from Syngal et al.[437]

^b^Evolving data suggest a potential association between Lynch syndrome and breast and prostate cancers. (Refer to the Additional cancers potentially associated with Lynch syndrome section of this summary for more information about these cancers.)

^c^Howlader et al.[438]

^d^Range of cancer risk estimates vary based on study sample size, subject ascertainment, and statistical methods.

###### Additional cancers potentially associated with Lynch syndrome

Additional tumors are being considered as part of the spectrum of Lynch syndrome, but this is controversial. Breast and prostate cancers have been raised as possible Lynch syndrome–associated tumors such that MMR genes are now included on multigene (panel) tests for these cancers.

###### Breast cancer

The issue of breast cancer risk in Lynch syndrome has been controversial.

Retrospective studies have been inconsistent, but several have demonstrated microsatellite instability in a proportion of breast cancers from individuals with Lynch syndrome;[452-455] one of these studies evaluated breast cancer risk in individuals with Lynch syndrome and found that it is not elevated.[455] However, the largest prospective study to date of 446 unaffected carriers of pathogenic variants from the Colon Cancer Family Registry [415] who were followed for up to 10 years reported an elevated SIR of 3.95 for breast cancer (95% CI, 1.59–8.13; P = .001).[415] The same group subsequently analyzed data on 764 carriers of MMR gene pathogenic variants with a prior diagnosis of colorectal cancer. Results showed that the 10-year risk of breast cancer following colorectal cancer was 2% (95% CI, 1%–4%) and that the SIR was 1.76 (95% CI, 1.07–2.59).[456] A series from the United Kingdom composed of clinically referred Lynch syndrome kindreds, with efforts to correct for ascertainment, showed a twofold increased risk of breast cancer in 157 MLH1 carriers but not in carriers of other MMR variants.[457] Results from a meta-analysis of breast cancer risk in Lynch syndrome among 15 studies with molecular tumor testing results revealed that 62 of 122 breast cancers (51%; 95% CI, 42%–60%) in MMR pathogenic variant carriers were MMR-deficient. In addition, breast cancer risk estimates among a total of 21 studies showed an increased risk of twofold to 18-fold in eight studies that compared MMR variant carriers with noncarriers, while 13 studies did not observe statistical evidence for an association of breast cancer risk with Lynch syndrome.[458]

A number of subsequent studies have suggested the presence of higher breast cancer risks than previously published,[348,349,459,460] although this has not been consistently observed.[341] Through a study of 325 Canadian families with Lynch syndrome, primarily encompassing MLH1 and MSH2 carriers, the lifetime cumulative risk for breast cancer among MSH2 carriers was reported to be 22%.[459] Similarly, breast cancer risks were elevated in a study of 423 women with Lynch syndrome, with substantially higher risks among those with MSH6 and PMS2 pathogenic variants, compared with MLH1 and MSH2 pathogenic variants.[349] In fact, breast cancer risk to age 60 years was 37.7% for PMS2, 31.1% for MSH6, 16.1% for MSH2, and 15.5% for MLH1. These findings are consistent with another study of 528 patients with Lynch syndrome–associated pathogenic variants (including MLH1, MSH2, MSH6, PMS2, and EPCAM) in which PMS2 and MSH6 variants were much more frequent among patients with only breast cancer, compared with those with only colorectal cancer (P = 2.3 x 10^-5^).[348] Additional data to support an association of MSH6 with breast cancer were provided through a study of over 10,000 cancer patients across the United States who had genetic testing.[460] Findings indicated that MSH6 was associated with breast cancer with an odds ratio (OR) of 2.59 (95% CI, 1.35–5.44). Taken together, these studies highlight how the risk profile among patients with Lynch syndrome is continuing to evolve as more individuals are tested through multigene panel testing, with representation of larger numbers of individuals with PMS2 and MSH6 pathogenic variants compared with prior studies. In the absence of definitive risk estimates, individuals with Lynch syndrome are screened for breast cancer on the basis of family history.[461]

###### Prostate cancer

Prostate cancer was found to be associated with Lynch syndrome in a study of 198 families from two U.S. Lynch syndrome registries in which prostate cancer had not originally been part of the family selection criteria. Prostate cancer risk in relatives of carriers of MMR gene pathogenic variants was 6.3% at age 60 years and 30% at age 80 years, versus a population risk of 2.6% at age 60 years and 18% at age 80 years, with an overall HR of 1.99 (95% CI, 1.31–3.03).[422] A 2014 meta-analysis supports this association, finding an estimated RR of 3.67 (95% CI, 2.32–6.67) for prostate cancer in men with a known MMR pathogenic variant.[462] This risk is possibly increased in those with MSH2 pathogenic variants.[424,462] Notwithstanding prevalent controversy surrounding routine prostate-specific antigen (PSA) screening, the authors suggested that screening by means of PSA and digital rectal exam beginning at age 40 years in male MMR gene carriers would be “reasonable to consider.”[422] A study of 692 men with metastatic prostate cancer unselected for family history of cancer or age at diagnosis identified germline MMR pathogenic variants in four men (0.5%).[463] Currently, molecular and epidemiological evidence supports prostate cancer as one of the Lynch syndrome cancers. As with breast cancer,[462] additional studies are needed to define absolute risks and age distribution before surveillance guidelines for prostate cancer can be developed for carriers of MMR pathogenic variants. For more information about prostate cancer and Lynch syndrome, see the DNA mismatch repair genes (Lynch syndrome) section in Genetics of Prostate Cancer.

###### Adrenocortical cancer

In a series of 114 ACC cases, of which 94 patients had a detailed family history assessment and Li-Fraumeni syndrome was excluded, three patients had family histories that were suggestive of Lynch syndrome. The prevalence of MMR gene pathogenic variants in 94 families was 3.2%, similar to the proportion of Lynch syndrome among unselected colorectal and endometrial cancer patients. In a retrospective review of 135 MMR gene pathogenic variant–positive Lynch syndrome families from the same program, two probands were found to have had a history of ACC. Of the four ACCs in which MSI testing could be performed, all were MSS. These data suggest that if Lynch syndrome is otherwise suspected in an ACC index case, an initial evaluation of the ACC using MSI or IHC testing may be misleading.[423]

###### Other cancers

Several additional cancers have been found to be associated with Lynch syndrome in some studies, but further investigation is warranted. Table 12 compares the risk of these cancers in the general population with that of individuals with Lynch syndrome.

#### Management of Lynch syndrome

##### Screening and surveillance in Lynch syndrome

###### Colon cancer screening and surveillance in Lynch syndrome

Several aspects of the biologic behavior of CRC and its precursor lesion, the adenomatous polyp, in individuals with Lynch syndrome support a different approach to CRC screening in this population as compared with those recommendations for average-risk people in the general population. At present, the recommendations for cancer screening and surveillance in Lynch syndrome consider the differences in cancer risks as compared with those in the general population due to the causative germline deficiency in the MMR system. The following biological differences form the basis of the currently implemented screening strategies in Lynch syndrome:

- CRC and adenomas present at a younger age.
  CRCs in Lynch syndrome occur earlier in life than do sporadic cancers; however, the age of onset varies based on which of the MMR genes is altered. (Refer to the Prevalence, clinical manifestations, and cancer risks associated with Lynch syndrome section of this summary for more information about gene-specific age of onset of CRC.)
  Carriers of Lynch syndrome pathogenic variants have an increased risk of developing colon adenomas and the onset of adenomas appears to occur at a younger age than in pathogenic variant–negative individuals from the same families.[464] The risk of a carrier of MMR pathogenic variants developing adenomas has been reported to be 3.6 times higher than the risk in noncarriers.[464] By age 60 years, 70% of the carriers developed adenomas, compared with 20% of noncarriers. Most of the adenomas in carriers had absence of MMR protein expression and were more likely to have dysplastic features, compared with adenomas from control subjects.[464]
  In one study, the mean age at diagnosis of adenoma in carriers was 43.3 years (range, 23–63.2 y), and the mean age at diagnosis of carcinoma was 45.8 years (range, 25.2–57.6 y).[464]
- There is a right-sided predominance of colon cancer.
  A larger proportion of Lynch syndrome CRCs (60%–70%) occur in the right colon, suggesting that sigmoidoscopy alone is not an appropriate screening strategy and that a colonoscopy provides a more complete structural examination of the colon. Evidence-based reviews of surveillance colonoscopy in Lynch syndrome have been reported.[125,465,466] The incidence of CRC throughout life is substantially higher in patients with Lynch syndrome, suggesting that the most-sensitive test available should be used. (Refer to Table 13 for available colon surveillance recommendations.)
- The adenoma-carcinoma sequence is accelerated.
  The progression from normal mucosa to adenoma to cancer is accelerated,[467,468] suggesting that screening should be performed at shorter intervals (every 1–2 years) and with colonoscopy.[468-471] It has been demonstrated that carriers of MMR gene pathogenic variants develop detectable adenomas at an earlier age than do noncarriers.[464,464] It is not known whether this reflects a greater prevalence of adenomas or the presence of larger adenomas with better detection in Lynch syndrome.

###### Evidence for the use of colonoscopy for CRC screening and surveillance in Lynch syndrome

The risk of CRC in Lynch syndrome has been studied and updated in a Finnish screening trial, which spans from the early 1980s to present.[468,472] Over the course of this trial, the design of the longitudinal study has evolved. In the earliest period, information about each individual's variant status was unknown and study participants were eligible based on fulfillment of clinical criteria; the study consisted of some people with a previous cancer or adenoma diagnosis and others without such history who were undergoing asymptomatic screening while the comparison group was composed of individuals from those same families who refused screening. Many of these people (68%) had screening with x-ray contrast/barium enema. Colonoscopy was the approach used for carriers of MMR pathogenic variants when this information was obtainable and the interval between exams was shortened from 5 years to 3 years to 2 years, based on results from the study over time.

A 15-year controlled screening trial conducted in this series demonstrated a reduction in the incidence of CRC, CRC-specific mortality, and overall mortality with colonoscopy in individuals from Lynch syndrome families.[468] Colonic screening was provided at 3-year intervals in 133 individuals from Lynch syndrome families and 119 controls from these families had no screening. Among those screened, 8 individuals (6%) developed CRC compared with 19 control subjects (16%), for a risk reduction of 62% with screening. Furthermore, all CRCs in the screened group were local, causing no deaths, while there were 9 deaths caused by CRC in the control group. There was also a benefit in overall mortality in the screened group with 10 deaths in the screened group and 26 deaths in the control group (P = .003).

The series subsequently limited its attention to subjects without prior diagnosis of adenoma or cancer. The eligible 420 carriers of pathogenic variants had a mean age of 36 years and underwent an average of 2.1 colonoscopies, with a median follow-up of 6.7 years. Adenomas were detected in 28% of subjects. Cumulative risk of one or more adenomas by age 60 years was 68.5% in men and 48.3% in women. Notably, risk of detecting cancer in those free of cancer at baseline exam, and thus regarded as interval cancers, by age 60 years was 34.6% in men and 22.1% in women. The combined cumulative risk of adenoma or cancer by age 60 years was 81.8% in men and 62.9% in women. For both adenomas and carcinomas, about one-half were located proximal to the splenic flexure. While the rates for CRC despite colonoscopy surveillance appear high, the recommended short intervals were not regularly adhered to in this nonrandomized series. These authors recommended surveillance at 2-year intervals. This is in line with most consensus guidelines (refer to Table 13), in which the appropriate colonoscopy screening interval remains every 1 to 2 years. Analysis of colonoscopic surveillance data in 242 carriers of pathogenic variants 10 years after testing shows 95% compliance in surveillance procedures for CRC and endometrial cancer. Although not all CRCs were prevented, mortality was comparable with variant-negative relatives. However, this may be attributable to the modest sample size of the study.[472]

Individuals with Lynch syndrome are at an increased risk of developing synchronous CRC. Of 5,304 CRC cases in the Danish HNPCC Register, including 774 with Lynch syndrome, the relative risks of synchronous CRC (>1 CRC) diagnosed within 1 year of primary CRC for Lynch syndrome, familial CRC (cases meeting Amsterdam I or II criteria) and metachronous CRC (1 CRC at age <50 y or >2 CRCs at age >50 y) were 5.6, 3.2, and 1.9, respectively, compared with sporadic CRC. Thus, the increased risk of synchronous CRC in patients with a strong family history of CRC, and especially Lynch syndrome, should be considered in preoperative colonoscopic examinations.[473]

Given that colonoscopy is the accepted measure for colon cancer surveillance, preliminary data suggest that the use of chromoendoscopy, such as with indigo carmine, may increase the detection of diminutive, histologically advanced adenomas.[474,475]

When an adenoma is detected, the question of whether to test the adenoma for MSI/IHC is raised. One study of patients with prior CRC and known MMR pathogenic variants found eight of 12 adenomas to have both MSI and IHC protein loss.[476] However, the study authors emphasized that normal MSI/IHC testing in an adenoma does not exclude Lynch syndrome. Abnormal MSI/IHC are uncommon in the smallest adenomas, and more prevalent in adenomas larger than 8 mm, which also suggests that the MMR defect is acquired in the growing adenoma.[477]

Level of evidence (colon surveillance): 2ai

###### Special considerations: The impact of gene-specific variability in cancer risk on CRC screening recommendations in Lynch syndrome

Because of the variability of gene-specific CRC risks, experts in the field have proposed gene-specific screening and surveillance recommendations. For example, a European consortium [386] made a clinical recommendation for delaying the onset of colorectal and endometrial cancer screening to age 30 years, in line with their recommendation for later initiation of screening for carriers of MSH6 pathogenic variants. Additionally, a 2015 review by an ad hoc American virtual workgroup involved in the care of Lynch syndrome patients and families concluded that despite multiple studies indicating reduced penetrance in monoallelic PMS2 carriers, they could not recommend any changes to Lynch syndrome cancer surveillance guidelines for this group.[382]

Available recommendations for colon surveillance in individuals with Lynch syndrome are summarized in Table 13. Most organizations tailor surveillance recommendations for each specific gene.[123,478-480] All of the screening recommendations assume findings are normal. A more aggressive screening schedule might be considered on an individualized basis.

Table 13. Gene-Specific Practice Guidelines for Colon Surveillance of Lynch Syndrome^a^

Organization | MLH1 | MSH2 | MSH6 | PMS2 | EPCAM
NCCN (2024) [123] | High-quality colonoscopy at age 20–25 y or 2–5 y prior to earliest CRC in the family if it was diagnosed before age 25 y; repeat colonoscopy every 1–2 y | High-quality colonoscopy at age 20–25 y or 2–5 y prior to earliest CRC in the family if it was diagnosed before age 25 y; repeat colonoscopy every 1–2 y | High-quality colonoscopy at age 30–35 y or 2–5 y prior to earliest CRC in the family if it was diagnosed before age 30 y; repeat colonoscopy every 1–3 y | High-quality colonoscopy at age 30–35 y or 2–5 y prior to earliest CRC in the family if it was diagnosed before age 30 y; repeat colonoscopy every 1–3 y | NCCN recommends that EPCAM carriers be managed the same as MSH2 carriers. High-quality colonoscopy at age 20–25 y or 2–5 y prior to the earliest CRC in the family if it was diagnosed before age 25 y; repeat colonoscopy every 1–2 y
ESMO (2020) [480] | Colonoscopy at age 25 y or 5 y prior to earliest CRC if diagnosed before age 25 y; repeat every 1–2 y | Colonoscopy at age 25 y or 5 y prior to earliest CRC if diagnosed before age 25 y; repeat every 1–2 y | Colonoscopy at age 35 y or 5 y prior to earliest CRC if diagnosed before age 25 y^c^; repeat every 1–2 y | Colonoscopy at age 35 y or 5 y prior to earliest CRC if diagnosed before age 25 y; repeat every 1–2 y | Not addressed
British Society of Gastroenterology (BSG)/ Association of Coloproctology of Great Britain and Ireland (ACPGBI)/ United Kingdom Cancer Genetics Group (UKCGG) (2020) [478] | Colonoscopy at age 25 y; repeat every 2 y until age 75 y | Colonoscopy at age 25 y; repeat every 2 y until age 75 y | Colonoscopy at age 35 y; repeat every 2 y until age 75 y | Colonoscopy at age 35 y; repeat every 2 y until age 75 y | EPCAM carriers should be managed as those with MSH2 pathogenic variants
European guidelines from the EHTG and ESCP; updated Mallorca group guidelines (2021) [479] | Colonoscopy at age 25 y; repeat every 2–3 y | Colonoscopy at age 25 y; repeat every 2–3 y | Colonoscopy at age 35 y; repeat every 2–3 y | Colonoscopy at age 35 y; repeat every 2–3 y^d^ | Not addressed
U.S. Multi-Society Task Force on Colorectal Cancer (2014)^b^ [316] | Colonoscopy beginning at age 20–25 y for 2–5 y prior to earliest CRC if before age 25 y; repeat every 1–2 y^e^

CRC = colorectal cancer; EHTG = European Hereditary Tumor Group; ESCP = European Society of Coloproctology; ESMO = European Society for Medical Oncology; MMR = mismatch repair; NCCN = National Comprehensive Cancer Network.

^a^This table summarizes available guidelines from 2014 and later. Other organizations, including the American Cancer Society, have published guidelines before 2014.[481]

^b^U.S. Multi-Society Task Force on Colorectal Cancer includes the following organizations: American Academy of Family Practice, American College of Gastroenterology, American College of Physicians-American Society of Internal Medicine, American College of Radiology, American Gastroenterological Association, American Society of Colorectal Surgeons, and American Society for Gastrointestinal Endoscopy.

^c^Consider later age for MSH6 carriers.[480]

^d^Consider repeating colonoscopy every 5 years for PMS2 carriers.[479]

^e^Consider starting at age 30 for MSH6 carriers and 35 for PMS2 carriers. Consider annual colonoscopy for MMR carriers.[316]

###### Extracolonic cancer screening in Lynch syndrome

###### Endometrial cancer screening in Lynch syndrome

Note: A separate PDQ summary on Endometrial Cancer Screening in the general population is also available.

Cancer of the endometrium is the most common extracolonic cancer observed in Lynch syndrome families, affecting at least one female in about 50% of Lynch syndrome families. (Refer to the Endometrial cancer section of this summary for more information about gene-specific risks of endometrial cancer in carriers of MMR pathogenic variants.)

In the general population, the diagnosis of endometrial cancer is generally made when women present with symptoms like abnormal or postmenopausal bleeding. Endometrial sampling is performed to provide a histological specimen for diagnosis. Eighty percent of women with endometrial cancer present with stage I disease, and there are no data to suggest that the clinical presentation in women with Lynch syndrome differs from that in the general population.

Given their substantial increased risk of endometrial cancer, endometrial cancer screening has been suggested for women with Lynch syndrome who have not had risk-reducing hysterectomies. Proposed screening methods include transvaginal ultrasound (TVUS) (not recommended in premenopausal patients) and/or endometrial biopsy. However, current NCCN guidelines suggest that these screening methods may not benefit women with Lynch syndrome. Screening via endometrial biopsy can be considered in patients with Lynch syndrome, due to its high levels of sensitivity and specificity. Screening may begin at age 30 to 35 years and can be repeated every 1 to 2 years. TVUS, on the other hand, is not sensitive or specific at detecting endometrial cancer. However, this screening method can be considered in women with Lynch syndrome based on a provider's judgment.[123]

Two studies have examined the use of TVUS in endometrial screening for women with Lynch syndrome.[482,483] In one study of 292 women from Lynch syndrome families or "Lynch syndrome-like/HNPCC-like" families, TVUS did not detect any endometrial cancer cases. However, two interval cancers developed in symptomatic women.[482] In a second study, 41 women with Lynch syndrome were enrolled in a TVUS screening program. Of 179 TVUS procedures performed, 17 scans were abnormal. Three of the 17 women with abnormal scans had complex atypical hyperplasia on endometrial sampling, while 14 had normal endometrial sampling. However, TVUS failed to identify one patient who presented with abnormal bleeding 8 months after a normal TVUS was performed; this patient was diagnosed with stage IB endometrial cancer.[483] Both of these studies concluded that TVUS is neither sensitive nor specific.

A study of 175 women with Lynch syndrome, which included both endometrial sampling and TVUS, showed that endometrial sampling improved sensitivity when compared with TVUS. Endometrial sampling found 11 of the 14 cases of endometrial cancer. Two of these cases were interval cancers that developed in symptomatic women, and one case was an occult endometrial cancer found at the time of hysterectomy. Endometrial sampling also identified 14 additional cases of endometrial hyperplasia. Among the group of 14 women with endometrial cancer, ten also had TVUS screening with endometrial sampling. Four of the ten women had abnormal TVUS, while six women had normal TVUS.[484] While this cohort study demonstrated that endometrial sampling may have benefits over TVUS for endometrial screening, there are no data that predict that screening with any other modality has benefits for endometrial cancer survival in women with Lynch syndrome.

Some studies suggest that women with a clinical or genetic diagnosis of Lynch syndrome do not participate in intensive gynecologic screening.[485,486] (Refer to the Gynecologic cancer screening for Lynch syndrome section in the Psychosocial Issues in Hereditary Colon Cancer Syndromes section of this summary for more information.)

Level of evidence: 5

###### Ovarian cancer screening in Lynch syndrome

Estimates of the cumulative lifetime risk of ovarian cancer in Lynch syndrome patients range from 3.4% to 22%.[4,365,440-442] NCCN does not recommend routine ovarian cancer screening in individuals with Lynch syndrome. However, CA-125 and pelvic ultrasound are recommended for planning risk-reducing surgery.[123]

Level of evidence: None assigned

###### Risk-reducing surgeries for the prevention of gynecologic cancers in Lynch syndrome

Risk-reducing surgery is an effective strategy for preventing endometrial and ovarian cancers in Lynch syndrome families. A retrospective study of 315 women with pathogenic MMR gene variants compared the rate of endometrial and ovarian cancers among women who did and did not have hysterectomies and oophorectomies. The mean follow-up periods for endometrial cancer were 13.3 years in the surgical group and 7.4 years in the nonsurgical group. The mean follow-up periods for ovarian cancer were 11.2 years in the surgical group and 10.6 years in the nonsurgical group. In the surgical group, no cancers were diagnosed. In contrast, 33% of women were diagnosed with endometrial cancer, and 5.5% of women were diagnosed with ovarian cancer in the nonsurgical group.[487] Cost-effectiveness–analysis modeling of risk-reducing surgeries (prophylactic hysterectomy and bilateral salpingo-oophorectomy) versus nonsurgical screening was conducted in a theoretical population of 30-year old MMR pathogenic variant carriers. This analysis revealed that prophylactic surgery was cost-effective and yielded higher QALY.[447] A subsequent modeling study evaluated multiple screening and surgical strategies. This study found that annual screening beginning at age 30 years followed by risk-reducing surgery at age 40 years was the most effective strategy.[488]

Level of evidence: 3aii

###### Additional extracolonic cancer screening in Lynch syndrome

The decision to screen for other Lynch syndrome–associated cancers is done on an individual basis and relies on the cancers reported among FDRs and SDRs with Lynch syndrome.

###### Gastric and small bowel cancers

The lifetime risk of gastric cancer is approximately 8% for male Lynch syndrome carriers and 5% for female Lynch syndrome carriers.[443] Recent epidemiological data report a decreasing trend in the diagnosis of gastric cancer than was previously reported, which was as high as 13%. The histological characterization of most Lynch syndrome–associated gastric cancers are of the intestinal type and may therefore be detected using screening esophagogastroduodenoscopy (EGD).[443,489] NCCN recommends that EGD with random biopsy of the proximal and distal stomach be initiated at age 30 to 40 years in individuals with Lynch syndrome. This screening can be repeated every 2 to 4 years. Screening can be initiated before age 30 years if any of the following are present: a family history of cancers in the upper GI system, incomplete or extensive gastric intestinal metaplasia, gastric/duodenal adenomas, or Barrett's esophagus with dysplasia. Other risk factors for gastric cancer include the following: male sex, older age, an MLH1 or MSH2 pathogenic variant, Asian ethnicity, residing in or emigrating from countries with a high background incidence of gastric cancer, and chronic autoimmune gastritis.[123]

There are variable reports on the lifetime risk of small bowel cancer associated with Lynch syndrome, ranging from less than 1% to 12%.[4,371,439-441,444] Approximately 6.9% of all duodenal cancer cases are attributed to Lynch syndrome.[79] Most small bowel malignancies are confined to the duodenum and the ileum, which are within endoscopic reach using EGD and colonoscopy (with dedicated ileal intubation), respectively. Other modalities to assess for small bowel lesions include CT enterography and capsule endoscopy but cost-effectiveness analyses do not support use of these evaluations for routine screening in Lynch syndrome.[442]

In a single-center retrospective study, researchers analyzed the prevalence of clinically actionable endoscopic findings in 323 asymptomatic Lynch syndrome carriers undergoing EGD for upper GI cancer surveillance.[490] Sixty-five clinically actionable findings were identified in 57 patients (17.6%), including five individuals with upper GI cancers (1.5%)–which were all detected at an early stage. Cancers were diagnosed at a mean age of 60.2 years (range, 50–73 y). Three of the individuals with upper GI cancers were women. Four out of five individuals with upper GI cancers had an MSH2 pathogenic variant, and one had an MLH1 pathogenic variant. One patient had Barrett's esophagus–related esophageal adenocarcinoma, one patient had a type 3 gastric neuroendocrine tumor, one patient had a gastric adenocarcinoma, and two patients had duodenal adenocarcinomas. These malignancies were detected in Lynch syndrome carriers on baseline EGDs or up to 16 months after surveillance EGDs. The study’s investigators concluded that additional research is needed to investigate the upper GI cancers that developed in the short interval between EGDs.

Esophageal findings in this study included Barrett’s esophagus, which was detected in 6.5% of participants. This percentage is similar to the prevalence of Barrett's esophagus in North American individuals with gastroesophageal reflux disease.[490]

In addition, 261 subjects underwent gastric biopsy sampling, and the following findings were observed:

- Ten patients had H. pylori (3.8%).
- Fifteen patients had gastric intestinal metaplasia (5.7%).
- Five patients had duodenal adenomas (1.5%) at a mean age of 55.8 years (range, 27–75 y). One patient had an adenoma with high-grade dysplasia, and one patient had an adenoma with tubulovillous histology. Four adenomas were found in the third part of the duodenum, and one adenoma was found in the second part of the duodenum.
- Two patients had gastric adenomas (0.6%). One of these patients had an adenoma with high-grade dysplasia. Patients had gastric adenomas at a mean age of 71.6 years (range, 70–73 y).

EGD surveillance is strongly recommended in patients with Lynch syndrome, given the high prevalence and high incidence of clinically actionable findings on EGD and the favorable benefit of identifying these findings at an early stage.

Level of evidence: 5

###### Urinary tract cancer

Urinary tract malignancies include those of the transitional cell type of the renal pelvis and ureters, and the bladder. The associated lifetime risk of these malignancies is variable, ranging from less than 1% to as high as 25%, with higher estimates related to pooling the cancers found in different locations within the urinary tract and including the bladder.[4,371,440,441,444,445] Studies that have evaluated urinary cytology as a potential screening modality revealed that it was associated with low sensitivity and a high false-positive rate and ultimately leads to additional evaluation that is often invasive (i.e., cystoscopy). Screening for renal pelvis, ureter, and/or bladder cancers is generally not recommended in individuals with Lynch syndrome. However, NCCN suggests considering urothelial cancer surveillance for individuals with a family history of urothelial cancer or for individuals (especially men) with an MSH2 pathogenic variant. Annual urinalysis can begin at age 30 to 35 years in these individuals.[123]

Level of evidence: 5

###### Pancreatic cancer

An elevated risk of pancreatic cancer among Lynch syndrome carriers has been supported by two cohort studies that adjust for ascertainment bias. One study reported a cumulative risk of pancreatic cancer of 3.7% by age 70 years and an 8.6-fold increase compared with the general population. [451] Another prospective study using data from the Colon Cancer Family Registry reported an SIR of 10.7 with cumulative risk of 0.95%.[415] Results of these studies have supported an expert consensus that recommended screening for pancreatic cancer in individuals with Lynch syndrome and an FDR with pancreatic cancer, similar to other high-risk populations with comparable risk.[491]

Pancreatic cancer screening may be considered in individuals with MLH1, MSH2, or MSH6 pathogenic variants if they have one or more FDRs or SDRs with exocrine pancreatic cancer (if these family members are on the same side of the family as the individual with Lynch syndrome). Pancreatic cancer screening can begin at age 50 years or 10 years before the youngest pancreatic cancer diagnosis in the family. Screening typically consists of annual contrast-enhanced magnetic resonance imaging/magnetic resonance cholangiopancreatography (MRCP) and/or endoscopic ultrasound (EUS). However, screening can be done more frequently if abnormal findings are found on MRCP/EUS. NCCN recommends that MRCP/EUS occur at a high-volume center that has experience screening individuals with Lynch syndrome. Health care providers are encouraged to have a discussion with patients about pancreatic screening limitations, including the following: the cost of annual pancreatic cancer screening, the high occurrence of benign and indeterminate pancreatic lesions, and the uncertainty regarding the effectiveness of pancreatic cancer screening.[123]

Level of evidence: 5

##### Chemoprevention in Lynch syndrome

The Colorectal Adenoma/Carcinoma Prevention Programme (CAPP2) was a double-blind, placebo-controlled, randomized trial to determine the role of aspirin in preventing CRC in patients with Lynch syndrome who were in surveillance programs at a number of international centers.[492] The study randomly assigned 861 participants (mean age, 45 y) to receive aspirin (600 mg/day), aspirin-placebo, resistant starch (30 g/day), or starch-placebo for up to 4 years. Initial CAPP2 trial results for 746 Lynch syndrome patients enrolled in the study were published in 2008 [493] and failed to show a significant preventive effect on incident colonic adenomas or carcinomas (relative risk, 1.0; 95% CI, 0.7–1.4) with a short-term follow-up (mean, 29 months; range, 7–74 months). In 2011 (mean follow-up, 55.7 months), subsequent data were published on 861 individuals randomly assigned to receive aspirin versus aspirin-placebo, which demonstrated that participants who completed at least 2 years of aspirin (per-protocol analysis) had significantly fewer incident CRCs than individuals randomly assigned to receive aspirin-placebo (HR, 0.41; 95% CI, 0.19–0.86, P = .02; incidence rate ratio [IRR], 0.37; 95% CI, 0.18–0.78, P = .008), although there was no significant difference by intention-to-treat analysis (HR, 0.63; 95% CI, 0.35–1.13, P = .12).[492]

In 2020, long-term follow-up data with all participants having surpassed 10 years of follow-up demonstrated a significant reduction in CRC incidence for participants randomly assigned to receive aspirin both by per-protocol analysis (HR, 0.56; 95% CI, 0.34–0.91) and intention-to-treat analysis (HR, 0.65; 95% CI, 0.43–0.97).[494] These long-term data showed that the protective effects of aspirin did not emerge until approximately 5 years after initiation of aspirin and, intriguingly, the protective effects of aspirin (taken in this study for only a finite period of time, although the data on aspirin use post unblinding do not exist) persisted to at least 20 years of follow-up. These data demonstrated that only 24 Lynch syndrome carriers needed to be treated with this finite course of aspirin to prevent one incident CRC. Female CAPP2 participants randomly assigned to receive aspirin versus aspirin-placebo also developed fewer incident endometrial cancers (7 vs. 17 cases), although this difference did not reach statistical significance (HR, 0.50; 95% CI, 0.22–1.11, P = .09). There was no significant difference seen in the incidence of cancers other than CRC and endometrial cancer in individuals randomly assigned to receive aspirin versus aspirin-placebo. There were no significant differences in adverse events between the aspirin and placebo groups, and no serious adverse effects were noted with any treatment.[492] The CAPP2 investigators concluded that aspirin 600 mg/day has a clear benefit for protecting against CRC in individuals with Lynch syndrome. A key limitation of the CAPP2 trial is that the frequency of surveillance studies at the various centers was not reported as being standardized.

To date, there has been no significant preventive benefit identified in CAPP2 participants randomly assigned to receive resistant starch versus starch-placebo (HR for incident CRC, 0.92; 95% CI, 0.62–1.34; P = .63).[495] However, at a planned 10-year follow-up, participants who had been randomized to receive resistant starch had significantly fewer non-CRC Lynch syndrome cancers than patients who received starch-placebo (IRR, 0.52; 95% CI, 0.32–0.84; P = .0075). This difference seems to have been driven by reduced rates of incident upper-GI tract cancers (gastric, pancreas, biliary, and small bowel cancers).There were 5 upper-GI cancers in participants randomized to take resistant starch and 21 upper-GI cancers in those randomized to take starch-placebo. The biological mechanisms that led to reduced upper-GI tract cancer incidence in Lynch syndrome patients who took resistant starch remain speculative. However, this data have renewed interest in the potential for dietary interventions to be a component of Lynch syndrome cancer prevention.

Experts have speculated that certain Lynch syndrome carriers with lower risks of future incident CRCs (e.g., those with germline PMS2 pathogenic variants, those with prior colectomy, or older individuals) may be less likely to derive benefit from aspirin chemoprevention and may be appropriate for lower dosing.[496] Furthermore, a subgroup analysis of the CAPP2 study also suggested that the chemopreventive effects may be primarily in obese individuals,[497] suggesting that efforts to personalize aspirin chemoprevention recommendations may be appropriate in Lynch syndrome.

The CAPP3 trial, which is evaluating the effect of lower doses of aspirin (blinded 100 mg, 300 mg, and 600 mg enteric-coated aspirin) completed accrual of 1,882 Lynch syndrome carriers in 2019 and data are not expected until at least 5 years of follow-up is complete.[498]

Because of the level 1 evidence in support of aspirin chemoprevention, clinical practice guidelines consistently recommend that individuals with Lynch syndrome consider taking aspirin daily. Optimal aspirin dosage can be determined by the patient's provider, after having a discussion with the patient about his/her personal risk factors (including pregnancy, in which aspirin use may be contraindicated). NCCN also recommends that providers explain potential advantages and disadvantages of aspirin use to the patient.[123]

For Lynch syndrome carriers unable to take aspirin, it is unclear whether NSAIDs may have a comparable chemopreventive benefit. A 2015 survey of 1,858 participants in the Colon Cancer Family Registry suggested that aspirin and ibuprofen might both reduce incident CRC in Lynch syndrome carriers.[499] Additionally, a recent translational study demonstrated that Lynch syndrome carriers randomly assigned to take naproxen for 6 months had significantly lower colorectal mucosal prostaglandin E2 (versus those randomly assigned to take placebo), and that this was accompanied by immune cell activation and gene expression patterns consistent with epithelial differentiation, suggesting the potential underlying mechanism for CRC chemoprevention in Lynch syndrome.[500]

Level of evidence: 1aii

##### Management of Lynch syndrome-associated CRC

###### Surgical management of CRC in Lynch syndrome

One of the hallmark features of Lynch syndrome is the presence of synchronous and metachronous CRCs. The incidence of metachronous CRCs has been reported to be 16% at 10 years, 41% at 20 years, and 63% at 30 years after segmental colectomy.[407] Because of the increased incidence of synchronous and metachronous neoplasms, the recommended surgical treatment for a patient with Lynch syndrome with neoplastic colonic lesions is generally an extended colectomy (total or subtotal). Nevertheless, treatment has to be individualized and has often included segmental colectomy. Mathematical models suggest that there are minimal benefits of extended procedures in individuals older than 67 years, compared with the benefits seen in younger individuals with early-onset cancer. In one Markov decision analysis model, the survival advantage for a young individual with early-onset CRC undergoing an extended procedure could be up to 4 years longer than that seen in the same individual undergoing a segmental resection.[501] The recommendation for an extended procedure must be balanced with the comorbidities of the patient, the clinical stage of the disease, the wishes of the patient, and surgical expertise. No prospective or retrospective study has shown a survival advantage for patients with Lynch syndrome who underwent an extended resection versus a segmental procedure.

Two studies have shown that patients who undergo extended procedures have fewer metachronous CRCs and additional surgical procedures related to CRC than do patients who undergo segmental resections.[407,502] Balancing functional results of an extended procedure versus a segmental procedure is of paramount importance. Although most patients adapt well after an abdominal colectomy, some patients will require antidiarrheal medication. A decision model compared QALYs for a patient aged 30 years undergoing an abdominal colectomy versus a segmental colectomy.[503] In this model, there was not much difference between the extended and segmental procedure, with QALYs being 0.3 years more in patients undergoing a segmental procedure than in those undergoing an extended procedure.[503]

A retrospective study from the Creighton University Hereditary Cancer Center evaluated the incidence of metachronous CRC and survival in 64 Lynch syndrome pathogenic variant carriers with right-sided colon cancer undergoing either proximal colectomy or total or subtotal colectomy.[504] Disease incidence was lower in those undergoing a more extensive resection, with one of 16 patients (6.3%) developing metachronous CRC. In those undergoing proximal colectomy, metachronous CRC developed in 13 of 48 patients (27%). There was no statistical difference in survival within a 25-year period after initial surgery. The authors concluded that the treatment of Lynch syndrome patients with right-sided colon cancer at presentation should be individualized to consider quality of life, functional outcomes, and patient preferences.

When considering surgical options, it is important to recognize that a subtotal or total colectomy will not eliminate the rectal cancer risk. The lifetime risk of developing cancer in the rectal remnant after an abdominal colectomy has been reported to be 12% at 12 years post-colectomy.[505] In addition to the general complications of surgery are the potential risks of urinary and sexual dysfunction and diarrhea after an extended colectomy; these risks increase as the anastomosis becomes more distal. Therefore, the choice of surgery must be made on an individual basis by the surgeon and the patient.

In patients with Lynch syndrome and rectal cancer, similar surgical options (extended vs. segmental resection) and considerations must be given. Extended procedures include restorative proctocolectomy and IPAA if the sphincter can be saved, or proctocolectomy with loop ileostomy if the sphincter cannot be saved. The risk of metachronous colon cancer after segmental resection for an index rectal cancer has been reported to be between 15% and 27%.[456,506] Two retrospectives studies reported a 15% and 18% incidence of metachronous colon cancer after segmental rectal cancer–resection in patients with Lynch syndrome.[507,508] In one of the studies, the combined risk of metachronous high-risk adenomas and cancers was 51% at a median follow-up of 101.7 months after proctectomy.[508]

There are no data about fertility after surgery in Lynch syndrome patients. In female FAP patients, no difference in fecundity after abdominal colectomy and IRA has been reported, whereas there is a 54% decrease in fecundity in patients who undergo restorative proctocolectomy with IPAA compared with the general population.[509] Another study in which a questionnaire was sent to FAP patients reported a similar prevalence of fertility problems among patients who had undergone IRA, IPAA, and proctocolectomy with end ileostomy. In that study, it was reported that earlier age at the time of surgery was associated with more fertility problems.[510]

In a large Danish registry study, the incidence rate for metachronous CRC was fivefold higher in Lynch syndrome patients, but not significantly higher in familial CRC and moderate familial risk CRC cases when compared with sporadic CRC, demonstrating that the risk of metachronous CRC occurred almost exclusively in Lynch syndrome cases.[473] The IRRs for metachronous CRC were highest in Lynch syndrome patients with MLH1 and MSH2 germline alterations, intermediate in MSH6 carriers, but not in PMS2 carriers when compared with sporadic CRC cases. Furthermore, when comparing the extent of the colon resections performed for primary CRC in Lynch syndrome cases, the IRRs for metachronous CRC were 5.5 for total and subtotal colectomies and 0.9 for segmental colon resections. The absolute risk reduction of metachronous CRC in Lynch syndrome cases with a primary CRC diagnosed before age 60 years and total/subtotal versus segmental colectomies was 63.5% in men and 40.9% in women. These results strongly support subtotal or total versus segmental colectomies for resectable CRC in Lynch syndrome patients with underlying MLH1 or MSH2, and possibly MSH6 germline alterations.

Most clinicians who treat patients with Lynch syndrome will favor an extended procedure at the time of CRC diagnosis. However, as stated above, the choice of surgery must be made on an individual basis by the surgeon and the patient.[511-513]

Level of Evidence: 4

###### Prognostic and therapeutic implications of MSI

As discussed in previous sections, MSI is not only a molecular feature of Lynch syndrome but is also present in 10% to 15% of sporadic cases of CRC (largely due to MLH1 hypermethylation or biallelic somatic variants in an MMR gene). Although MSI testing was initially used to screen patients who might harbor pathogenic MMR gene variants, it has been increasingly recognized that MSI has important prognostic and therapeutic implications. The utility of MSI testing beyond identifying Lynch syndrome has made the case for universal MSI screening more compelling and has contributed to its widespread adoption. Several studies have suggested that stage-specific survival is better for MSI-H CRC compared with MSS cancers. Additionally, the chemotherapeutic agent fluorouracil (5-FU) appears ineffective in the adjuvant treatment of resected MSI-H CRC, in contrast to MSS CRC in which this agent is widely utilized for this purpose. Finally, immunomodulation with agents such as checkpoint inhibitors appears effective in the treatment of advanced MSI-H CRC based on early phase 1 and phase 2 studies, while these agents, at least when utilized as monotherapy, show little activity in MSS CRC.

###### Prognosis of MSI

Although MSI-H tumors account for 15% of all sporadic CRC, they appear to be more frequent in stage II compared with stage III CRC,[514] and are even less common in metastatic disease, being present in only 3% to 4% of metastatic cases.[515] This stage distinction alludes to the possibility of a better prognosis associated with underlying MSI-H status.

Several studies subsequently confirmed the improved survival of stage II MSI-H CRC compared with MSS cases. A meta-analysis of 32 studies of 7,642 cases, including 1,277 with MSI-H, showed a combined HR estimate for overall survival (OS) associated with MSI of 0.65 (95% CI, 0.59–0.71; heterogeneity P = .16; I^2^ [a measure of the percentage of variation across studies that is due to heterogeneity rather than chance] = 20%).[516] However, while data were limited, tumors with MSI derived no benefit from adjuvant 5-FU (HR, 1.24; 95% CI, 0.72–2.14). Subsequent data from several large randomized clinical trials confirmed the favorable prognosis associated with MSI-H. These included the QUick And Simple And Reliable (QUASAR) trial, which explored the benefit of adjuvant 5-FU–based chemotherapy compared with surgery alone in 1,900 patients with resected stage II CRC. In this study, MSI-H tumors were associated with a recurrence risk of half that of MSS tumors (risk ratio [RR], 0.53; 95% CI, 0.40–0.70).[517] Similar results were seen in the Pan European Trial Adjuvant Colon Cancer (PETACC)-3 trial, a randomized trial of 5-FU with or without irinotecan in resected stage II or stage III CRC.[518] MSI-H status was associated with an OS odds ratio (OR) of 0.39 (95% CI, 0.24–0.65) and this advantage was seen in both stage II and stage III disease.

Consistent with other prior data, clinicopathologic analysis of 85 Lynch syndrome–associated CRCs and 67 sporadic dMMR CRCs demonstrated a significantly superior survival among patients with Lynch syndrome, as well as younger ages at diagnosis and higher numbers of tumor-infiltrating lymphocytes (TILs).[519] Exome sequencing and neoantigen data from a subset of 16 CRC tumors (eight Lynch syndrome CRCs and eight sporadic dMMR CRCs) from this cohort suggest that somatic mutational burden and neoantigen load is significantly higher among Lynch syndrome–associated CRCs than sporadic dMMR CRCs; this was speculated to be the source of the improved survival outcomes and increased TILs.

Given the predilection for MSI-H tumors to involve the right side of the colon, there is a paucity of data on the outcome and prognosis of MSI-H tumors involving the rectum. One study suggested only 2% of rectal cancers are MSI-H.[517] A study of 62 patients with MSI-H rectal cancers from a single institution were followed for a median of 6.8 years. The 5-year rectal cancer–specific survival was 100% for stage I and stage II, 85.1% for stage III, and 60.0% for stage IV disease, suggesting the favorable prognosis associated with MSI-H may also apply to cancers involving the rectum.[506] The authors additionally reported a favorable 26% pathological complete response rate with 5-FU combined with radiation therapy, suggesting that 5-FU given with radiation for the locoregional treatment of rectal cancer may still be effective in the setting of MSI-H tumors. The substantial rate of pathological complete responses demonstrated in this study also reinforces the need for adequate biopsies to assess MSI status before commencing treatment.

###### The use of adjuvant chemotherapy after surgery for CRC in Lynch syndrome

The finding of MSI in a CRC has been shown in several studies to predict the lack of benefit of adjuvant chemotherapy with 5-FU in resected stage II or stage III colon cancer.[520] This has been a controversial area historically. It was known that loss of DNA MMR activity in cultured colon cancer cells conferred resistance to DNA-damaging agents (the common mechanism of cytotoxic chemotherapy) through loss of the signal to arrest the cell cycle in response to DNA damage that cannot be repaired.[521] This led to the prediction that DNA dMMR tumors may not be fully sensitive to alkylating agents, 5-FU, and platinum-containing drugs.[522-524] Unexpectedly, in 2000, a paper was published suggesting that patients with Dukes C (stage III) CRC with MSI had a substantial survival benefit when given 5-FU–based adjuvant chemotherapy.[525] However, the patients in this analysis had not been randomized to therapy; they were selected for adjuvant chemotherapy based upon clinical status, and inadvertently, the median age in the treatment group was 13 years younger than the controls.

In 2003, however, the outcomes in a randomized controlled prospective trial of adjuvant chemotherapy in 570 colon cancer patients demonstrated no benefit from adjuvant 5-FU in the group with MSI. Moreover, there were nonsignificant trends towards increased mortality when colon cancers with MSI were treated: twofold for stage III cancers and threefold for stage II cancers.[526] Subsequently, ten studies confirmed this, as all failed to show benefit when CRC patients were given 5-FU–based chemotherapy.[520] In contrast, a meta-analysis of randomized trials of 5-FU versus observation suggested a potential benefit of 5-FU in patients with MSI stage III disease. An exploratory subset analysis suggested benefit only in those patients with Lynch syndrome–related MSI. An analysis of stage II patients was not undertaken in this study.[527]

Preclinical data suggests the addition of oxaliplatin to 5-FU can overcome the resistance to 5-FU monotherapy seen in MSI-H tumors.[528] A retrospective analysis of 433 MSI-H stage II and stage III CRC cases (both sporadic and secondary to Lynch syndrome) suggested a benefit in disease-free survival (DFS) with FOLFOX (5-FU and oxaliplatin) compared with surgery alone.[529] There was a trend towards improved DFS utilizing FOLFOX in the subset of patients with MSI due to Lynch syndrome, however, the result was not statistically significant. Additional studies have demonstrated similar survival outcomes irrespective of MSI status with adjuvant chemotherapy including FOLFOX.[530,531]

Level of evidence (against the use of adjuvant therapy): 1ai

###### Immunotherapy

Tumors that develop via the MSI pathway have more somatic variants than tumors that develop via other pathways. This could imply that dMMR tumors may have more potential antigens (termed neoantigens) and may be more responsive to immune system manipulation than proficient MMR (pMMR) tumors. Microscopically, MSI-H tumors often exhibit abundant tumor-infiltrating lymphocytes, sometimes resulting in a Crohn-like reaction. This histological feature has long suggested the possibility of increased tumor immune surveillance in MSI-H cancers and is one of the main hypotheses for the better stage-specific survival seen in MSI-H compared with MSS cancers.

To test the hypothesis of efficacy of immunomodulation in MSI-H tumors, a phase 2 trial of programmed cell death-1 (PD-1) inhibition was carried out in a small cohort of patients with MSI-H or MSS cancers. Patients with metastatic disease that had failed various chemotherapy regimens were treated with pembrolizumab, an anti–PD-1 immune checkpoint inhibitor.[532] In this small phase 2 study, 32 patients with CRC (11 were dMMR, 21 were pMMR, and 9 others had noncolorectal dMMR tumors) were treated with intravenous pembrolizumab every 14 days. The immune-related response among evaluable patients was 40% (4 of 10) for dMMR CRC tumors, 0% (0 of 18) for pMMR CRC tumors, and 71% (5 of 7) for non-CRC dMMR tumors. The immune-related 20-week progression-free survival was 78% (7 of 9) in patients with dMMR CRC tumors, 11% (2 of 18) in patients with pMMR CRC tumors, and 67% (4 of 6) in patients with non-CRC dMMR tumors. dMMR tumors had a mean of 24-fold more somatic variants than pMMR tumors. Additionally, in this study somatic variants load was associated with prolonged PFS. The authors concluded that MMR status predicted clinical benefit to immune checkpoint blockade with pembrolizumab.

A single-arm phase 2 study (CheckMate 142 (https://www.cancer.gov/clinicaltrials/NCT02060188)) of another PD-1 inhibitor, nivolumab, was performed in 74 patients with MSI-H/dMMR CRC that had progressed on prior cytotoxic chemotherapy (including 5-FU, irinotecan, and oxaliplatin).[533] Overall, 31% of patients (23 of 74) experienced an objective response to therapy, and 69% (51 of 74) had disease control for at least 12 weeks. Among patients who responded to nivolumab, the median duration of response was not reached at the time of study analysis (median follow up of 12 months). There was no significant difference in the response rates among individuals with Lynch syndrome–associated metastatic MSI-H/dMMR CRC versus non-Lynch metastatic MSI-H/dMMR CRC in this study. Twenty percent of study participants experienced grade 3 or greater toxicities, most commonly elevations in amylase and/or lipase, and there were no deaths that were attributed to nivolumab.

Based on these data, pembrolizumab 200 mg given intravenously every 3 weeks was approved by the FDA in May 2017 for the treatment of any MSI-H/dMMR metastatic cancer that is refractory to standard therapy and nivolumab 240 mg given intravenously every 2 weeks was granted accelerated approval by the FDA in August 2017 for the treatment of MSI-H/dMMR CRC that is refractory to cytotoxic chemotherapy.

In 2020, treatment-naïve patients with MSI-H/dMMR CRC were enrolled in a phase III trial (KEYNOTE-177 (https://www.cancer.gov/clinicaltrials/NCT02563002)) where they were randomized to receive pembrolizumab or chemotherapy. Patients who received pembrolizumab had an increase in PFS when compared with patients who received chemotherapy.[534,535] Subsequently, pembrolizumab became the standard of care for treating metastatic MSI-H/dMMR CRC in the first-line setting. (Refer to the Colon Cancer Treatment summary for more information.)

In another arm of CheckMate 142 (https://www.cancer.gov/clinicaltrials/NCT02060188), 119 individuals with metastatic dMMR CRC were treated with nivolumab plus ipilimumab.[536] The objective response rate was 55% with a 12-week disease control rate of 80%, a 12-month PFS of 71%, and a median duration of response that was not reached. Grade 3 and grade 4 toxicities occurred in 32% of participants (most commonly increased liver function tests) and 13% of all participants discontinued therapy due to toxicity. This was a nonrandomized study, and thus questions remain as to whether the combination of immune checkpoint blockade is superior to PD-1 inhibition alone, especially given the apparent increase in toxicity with combination therapy. On the basis of these data, in July 2018 the FDA granted accelerated approval to nivolumab plus ipilimumab therapy for the treatment of dMMR/MSI-H metastatic CRC that has progressed through prior chemotherapy with a fluoropyrimidine, oxaliplatin, and irinotecan.

A retrospective analysis described the pathological responses of 14 patients with MSI-H tumors after treatment with PD-1 inhibitors (with or without CTLA-4 inhibitors). Eight of the patients in this study had Lynch syndrome and all of the patients had unresectable/metastatic CRCs. Patients underwent resection after they completed treatment. The study demonstrated a pathological complete response (PCR) in 13 of the 14 patients, despite radiographic evidence of persistent disease in 12 of these patients. The discordance between imaging and PCR may be related to significant lymphocyte infiltration in patient tumors. The median duration of treatment was 12 months. However, a PCR was demonstrated in a patient who was treated for only 3 months.[537]

There is debate about when immunotherapeutic agents can be used in patients with non-CRC, MSI-H cancers. Many providers question in which line of therapy immunotherapeutics should be initiated. This question is the subject of multiple ongoing clinical trials. (Use our advanced clinical trial search (https://www.cancer.gov/about-cancer/treatment/clinical-trials/search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria.)

Level of evidence: 3b

###### Vaccines in the treatment or prevention of MSI-related CRC

An alternative approach to immunotherapy in MSI-H CRC involves the use of tumor-directed vaccines. The most promising approaches thus far involve the use of tumor-related neoantigens as epitopes to increase tumor-specific T-cell immunity. Studies are currently under way in the adjuvant treatment of resected stage III CRC (NCT01461148 (https://www.cancer.gov/clinicaltrials/NCT01461148)), in patients with metastatic disease (NCT01885702 (https://www.cancer.gov/clinicaltrials/NCT01885702)), and in the prevention of CRC in patients with Lynch syndrome (NCT01885702 (https://www.cancer.gov/clinicaltrials/NCT01885702)).

#### Lynch syndrome–related syndromes

##### Lynch-like or HNPCC-like syndrome

Somatic biallelic MMR gene inactivation is now recognized as a common cause of sporadic MMR deficiency. The literature variably labels these cases as Lynch-like syndrome (LLS). However, this nomenclature can be confusing, since this is a sporadic form of MMR-deficiency, rather than a stand-alone genetic syndrome. For more information, see the Somatic biallelic mismatch repair deficiency (sometimes called Lynch-like syndrome) section and Table 10.

### Hamartomatous Polyposis Syndromes

Hamartomatous polyposis syndromes are a distinct and rare group of polyposis diseases characterized by the presence of hamartomatous growths throughout the GI tract. Each syndrome manifests differently, depending on histological type, the number of GI polyps, the number of benign growths, GI cancer risks, and extra-GI cancer risks. Hamartomatous polyposis syndromes include the following:

- PTEN hamartoma tumor syndromes (PHTS) (including Cowden syndrome).
- Peutz-Jeghers syndrome (PJS).
- Juvenile polyposis syndrome (JPS).

#### PTEN hamartoma tumor syndromes (including Cowden syndrome)

Cowden syndrome and Bannayan-Riley-Ruvalcaba syndrome (BRRS) are part of a spectrum of conditions known collectively as PTEN hamartoma tumor syndromes (PHTS). Approximately 85% of patients diagnosed with Cowden syndrome, and approximately 60% of patients with BRRS have an identifiable PTEN pathogenic variant.[538] In addition, PTEN pathogenic variants have been identified in patients with very diverse clinical phenotypes.[539] The term PHTS refers to any patient with a PTEN pathogenic variant, irrespective of clinical presentation.

PTEN functions as a dual-specificity phosphatase that removes phosphate groups from tyrosine, serine, and threonine. PTEN pathogenic variants are diverse and can present as nonsense, missense, frameshift, or splice-site variants. Approximately 40% of variants are found in exon 5, which encodes the phosphatase core motif; several recurrent pathogenic variants have been observed at this location.[540] Pathogenic variants in the 5’ end of PTEN or within the phosphatase core of PTEN tend to affect more organ systems.[541]

Operational criteria for the diagnosis of Cowden syndrome have been published and subsequently updated.[542,543] These include major, minor, and pathognomonic criteria that consist of certain mucocutaneous manifestations and adult-onset dysplastic gangliocytoma of the cerebellum (Lhermitte-Duclos disease). An updated set of criteria based on a systematic literature review has been suggested [544] and is currently utilized in the National Comprehensive Cancer Network (NCCN) guidelines.[545] Contrary to previous criteria, the authors concluded that there was insufficient evidence for any features to be classified as pathognomonic. Increased genetic testing (especially multigene panels) has identified individuals with germline PTEN pathogenic variants who do not meet diagnostic criteria for PHTS. Diagnostic criteria will need to be reconciled with these recently discovered phenotypes. Hence, it is unclear whether PHTS diagnoses should be based on clinical features or a positive PTEN genetic test result. The American College of Medical Genetics and Genomics (ACMG) suggests that referral for genetics consultation be considered for individuals with a personal history of or a first-degree relative with the following: 1) adult-onset Lhermitte-Duclos disease or 2) any three of the major or minor criteria that have been established for the diagnosis of Cowden syndrome.[546] Detailed recommendations, including diagnostic criteria (https://www.nature.com/articles/gim2014147/tables/4) for Cowden syndrome, can be found in the NCCN and ACMG guidelines.[545,546] Additionally, a predictive model (http://www.lerner.ccf.org/gmi/ccscore/) that uses clinical criteria to estimate the probability of a PTEN pathogenic variant is available; a cost-effectiveness analysis suggests that germline PTEN testing is cost effective if the probability of a variant is greater than 10%.[547]

Over a 10-year period, the International Cowden Consortium (ICC) prospectively recruited a consecutive series of adult and pediatric patients meeting relaxed ICC criteria for PTEN testing in the United States, Europe, and Asia.[548] Most individuals did not meet the clinical criteria for a diagnosis of Cowden syndrome or BRRS. Of the 3,399 individuals recruited and tested, 295 probands (8.8%) and an additional 73 family members carried a germline PTEN pathogenic variant. The authors concluded that melanoma, kidney cancer, and colorectal cancer should be added to the spectrum of cancers associated with PTEN germline pathogenic variants (in addition to breast cancer, thyroid cancer, and endometrial cancer). This conclusion was based on the high melanoma, kidney, and colorectal cancer lifetime risk estimates found in individuals with PTEN pathogenic variants. A second study of approximately 100 patients with a germline PTEN pathogenic variant confirmed these findings and suggested a cumulative cancer risk of 85% by age 70 years.[549]

The age-adjusted risk of CRC was increased in individuals with PTEN pathogenic variants in both studies (SIR, 5.7–10.3).[548,549] In addition, one study found that 93% of individuals with PTEN pathogenic variants who had undergone at least one colonoscopy had polyps.[548] Hyperplastic polyps were the most common polyp histology identified, although adenomas and sessile serrated polyps were also observed. The increased CRC risk in individuals with PTEN pathogenic variants has led to the recommendation of surveillance colonoscopy in these patients.[549,550] However, both the age at which to begin (30–40 y) and the subsequent frequency of colonoscopies (biennial to every 3–5 y) vary considerably and are based on expert opinion.

Table 14. Cancer Risk in Individuals with Germline PTEN Pathogenic Variants^a^

Cancer | Age-Adjusted SIR (95% CI) | Age-Related Penetrance Estimates
Breast | 25.4 (19.8–32.0) | 85% starting around age 30 y^b^
Colorectal | 10.3 (5.6–17.4) | 9% starting around age 40 y
Endometrial | 42.9 (28.1–62.8) | 28% starting around age 25 y
Kidney | 30.6 (17.8–49.4) | 34% starting around age 40 y
Melanoma | 8.5 (4.1–15.6) | 6% with risk beginning in infancy
Thyroid | 51.1 (38.1–67.1) | 35% with risk beginning in infancy

CI = confidence interval; SIR = standardized incidence ratio.

^a^Adapted from Tan et al.[548]

^b^Other historical studies have suggested a lower lifetime risk of breast cancer, in the range of 25%–50%.[544] (Refer to the PTEN Hamartoma Tumor Syndromes [Including Cowden Syndrome] section in Genetics of Breast and Gynecologic Cancers for more information.)

#### Peutz-Jeghers syndrome

PJS is an early-onset autosomal dominant disorder characterized by melanocytic macules on the lips, the perioral region, and buccal region; and multiple GI polyps, both hamartomatous and adenomatous.[551-553] Germline pathogenic variants in the STK11 gene at chromosome 19p13.3 have been identified in the vast majority of PJS families.[554-558] GI cancers (including colorectal adenocarcinoma, gastric adenocarcinoma, small intestinal adenocarcinoma, and pancreatic adenocarcinoma) are some of the most common malignancies seen in individuals with PJS. PJS also increases the risk of developing cancers in other organs. For example, the cumulative risks have been estimated to be 32% to 54% for breast cancer [8,559,560] and 21% for ovarian cancer (mainly ovarian sex-cord tumors).[559] The risk of developing pancreatic cancer in individuals with PJS is estimated to be more than 100-fold higher than that of the general population (although these statistics are based on calculations from a small number of individuals with PJS).[559] A systematic review found a lifetime cumulative cancer risk, all sites combined, of up to 93% in patients with PJS.[559,561] Table 15 shows the cumulative risk of these tumors.

Females with PJS are also predisposed to the development of cervical adenoma malignum, a rare and very aggressive adenocarcinoma of the cervix.[562] In addition, females with PJS commonly develop benign ovarian sex-cord tumors with annular tubules, whereas males with PJS are predisposed to development of Sertoli-cell testicular tumors;[563] although neither of these two tumor types is malignant, they can cause symptoms related to increased estrogen production.

Although the risk of malignancy appears to be exceedingly high in individuals with PJS based on the published literature, the possibility that selection and referral biases have resulted in overestimates of these risks should be considered.

Table 15. Cumulative Cancer Risks in Peutz-Jeghers Syndrome Up To Specified Age^a^

Site | Age (y) | Cumulative Risk (%)^b^ | Reference(s)
Any cancer | 60–70 | 37–93 | [8 ,558 - 560 ,564 ,565]
Any GI cancer^c,d^ | 60–70 | 38–66 | [8 ,560 ,564 ,565]
Gynecological cancer | 60–70 | 13–18 | [8 ,560]
Per origin
Stomach | 65 | 29 | [559]
Small bowel | 65 | 13 | [559]
Colorectum | 65 | 39 | [8 ,559]
Pancreas | 65–70 | 11–36 | [8 ,559]
Lung | 65–70 | 7–17 | [8 ,559 ,560]
Breast | 60–70 | 32–54 | [8 ,559 ,560]
Uterus | 65 | 9 | [559]
Ovary | 65 | 21 | [559]
Cervix^e^ | 65 | 10 | [559]
Testes^e^ | 65 | 9 | [559]

GI = gastrointestinal.

^a^Reprinted with permission from Macmillan Publishers Ltd: Gastroenterology [561], copyright 2010.

^b^All cumulative risks were increased compared with the general population (P < .05), with the exception of cervix and testes.

^c^GI cancers include colorectal, small intestinal, gastric, esophageal, and pancreatic.

^d^Westerman et al.: GI cancer does not include pancreatic cancer.[564]

^e^Did not include adenoma malignum of the cervix or Sertoli cell tumors of the testes.

PJS is caused by pathogenic variants in the STK11 (also called LKB1) tumor suppressor gene located on chromosome 19p13.[555,556] Unlike the adenomas seen in familial adenomatous polyposis, the polyps arising in PJS are hamartomas. Studies of the hamartomatous polyps and cancers of PJS show allelic imbalance (LOH) consistent with the two-hit hypothesis, demonstrating that STK11 is a tumor suppressor gene.[566,567] However, heterozygous STK11 knockout mice develop hamartomas without inactivation of the remaining wild-type allele, suggesting that haploinsufficiency may be sufficient for initial tumor development in PJS.[568] Subsequently, the cancers that develop in STK11 +/- mice do show LOH;[569] indeed, compound mutant mice heterozygous for pathogenic variants in STK11 +/- and homozygous for pathogenic variants in TP53 -/- have accelerated development of both hamartomas and cancers.[570]

Germline variants of the STK11 gene represent a spectrum of nonsense, frameshift, and missense variants, and splice-site variants and large deletions.[8,554]

Approximately 85% of variants are localized to regions of the kinase domain of the expressed protein. No strong genotype-phenotype correlations have been identified.[8] Up to 30% of variants are large deletions involving one or more exons of STK11, underscoring the importance of deletion analysis in suspected cases of PJS.[554]

STK11 has been unequivocally demonstrated to cause PJS. Although earlier estimates using direct DNA sequencing showed a 50% pathogenic variant detection rate in STK11, studies adding techniques to detect large deletions have found pathogenic variants in up to 94% of individuals meeting clinical criteria for PJS.[554,561,571] Given the results of these studies, it is unlikely that other major genes cause PJS.

##### Clinical management

NCCN and the U.S. Multi-Society Task Force (USMSTF) on Colorectal Cancer recommend upper endoscopy and high-quality colonoscopy with polypectomy beginning between the ages of 8 to 10 years.[572,573]

Management of small bowel hamartomas is important because patients with PJS have risks of bleeding, intussusception, and malignancy. In PJS, cumulative lifetime risk of small bowel cancer is approximately 13%. NCCN guidelines recommend computed tomography enterography (CTE), magnetic resonance enterography (MRE), or video capsule endoscopy (VCE) beginning between the ages of 8 to 10 years for small bowel surveillance in PJS.[572] These studies are repeated at intervals that are based on study findings up to age 18 years. Afterwards, screening is repeated every 2 to 3 years. Few studies have directly compared yields of these different small bowel cancer surveillance tools. One Australian study of 20 patients with PJS undergoing paired VCE and MRE found that more small bowel polyps (>1 cm) were detected by VCE than MRE.[574] However, balloon enteroscopy detected more small bowel polyps (>1 cm) than both VCE and MRE. NCCN guidelines also include recommendations for other PJS manifestations.

#### Juvenile polyposis syndrome

JPS is a genetically heterogeneous, rare, childhood- to early adult–onset, autosomal dominant disease that presents characteristically as hamartomatous polyposis throughout the GI tract, although colorectal polyps predominate.[575] JPS can present with diarrhea, GI tract hemorrhage, protein-losing enteropathy, and prolapsing polyps.[575-577] JPS is characterized by the presence of a specific type of hamartomatous polyp called a juvenile polyp, often when a family history of JPS is present. In spite of the histological nomenclature, juvenile polyp diagnosis is based on the polyp's histological appearance, rather than the patient's age when a polyp is found. Solitary juvenile polyps of the colon/rectum are seen sporadically in infants and young children and do not imply a JPS diagnosis.

JPS can be diagnosed clinically (based on fulfillment of specific clinical criteria) or genetically (based on the presence of germline pathogenic variants in SMAD4 or BMPR1A).

A clinical diagnosis of JPS is met by individuals fulfilling one or more of the following criteria:[578]

1. More than five juvenile polyps of the colon or rectum.
2. Juvenile polyps in other parts of the GI tract.
3. Any number of juvenile polyps and a positive family history of JPS.

Approximately 15% to 60% of JPS cases have germline pathogenic variants in the SMAD4 gene, and 25% to 40% of cases have germline pathogenic variants in the BMPR1A gene.[575,579,580]

Individuals with germline SMAD4 pathogenic variants may have a greater risk to develop severe gastric polyposis [581] and hereditary hemorrhagic telangiectasia (HHT) (see the features of HHT below).[575]

Individuals with JPS and germline pathogenic variants in SMAD4/BMPR1A have a 38% to 68% lifetime risk of developing CRC by age 60 years, with an average diagnosis occurring between the ages of 34 and 44 years.[437,582,583] Individuals who have clinical diagnoses of JPS but no identifiable germline SMAD4/BMPR1A pathogenic variants likely have decreased CRC risk. The lifetime risk of gastric cancer in patients with JPS and germline pathogenic variants in SMAD4/BMPR1A has been estimated to be as high as 21%.[123,437] However, the incidences of gastric cancer and gastric polyposis appear to be far lower in individuals with clinical diagnoses of JPS who do not have identifiable germline pathogenic variants in SMAD4/BMPR1A.[583]

Roughly 22% of JPS patients with germline SMAD4 pathogenic variants also have manifestations of HHT, such as arteriovenous malformations, mucocutaneous telangiectasias, digital clubbing, osteoarthropathy, hepatic arteriovenous malformations, and cerebellar cavernous hemangioma, suggesting that the two syndromes overlap.[584] One small case series showed that patients with JPS can infrequently have an adenomatous oligopolyposis phenotype as well.[575,585,586]

NCCN and the USMSTF on Colorectal Cancer recommend that patients with JPS undergo both high-quality colonoscopy with polypectomy and upper endoscopy with polypectomy beginning between ages 12 and 15 years.[123,573] Various clinical practice guidelines recommend that patients with JPS and germline SMAD4 pathogenic variants undergo screening for HHT manifestations.[123,437,575,587]

A severe form of JPS, in which polyposis develops in the first few years of life, is referred to as JPS of infancy. JPS of infancy is often caused by microdeletions of chromosome 10q22-23, a region that includes BMPR1A and PTEN. For more information about PTEN, see the PTEN hamartoma tumor syndromes (including Cowden syndrome) section. The phenotype often includes features such as macrocephaly and developmental delay, possibly as a result of loss of PTEN function.[588] Recurrent GI bleeding, diarrhea, exudative enteropathy, in addition to associated developmental delay, are associated with a very high rate of morbidity and mortality in these infants, thereby limiting the heritability of such cases.[588]

### Oligopolyposis

Oligopolyposis (derived from the Greek prefix, oligo, meaning few) describes polyp counts that are greater than anticipated in average-risk patients but are fewer than 100 polyps. Here, oligopolyposis is used to describe situations in which an individual’s polyp count is large enough to suspect a hereditary polyposis syndrome (generally between 10–100 polyps), regardless of the presence or lack of a family history of colorectal polyps/CRC. Since oligopolyposis specifically refers to polyp count, multiple syndromes can present with an oligopolyposis phenotype. It is recommended that most individuals with oligopolyposis have germline genetic testing.[123] These individuals are managed with frequent endoscopic surveillance, based on their underlying hereditary syndrome or guided by their endoscopic presentation.

Multiple syndromes can present with oligopolyposis. These syndromes vary based on polyp histology and the pathogenic variant that is identified. FAP is the most well-described adenomatous polyposis syndrome that occasionally presents with fewer than 100 tubular adenomas. Since the APC gene was discovered in 1992 (pathogenic variants in APC cause FAP), other rare genes have also been implicated in oligopolyposis and cancer. These genes include NTHL1, POLE/POLD1, GREM1, MUTYH, and AXIN2. The hamartomatous polyposis syndromes and serrated polyposis syndrome (SPS) are nonadenomatous polyposis syndromes that can present with oligopolyposis. Individuals with adenomatous polyposis who do not have an identified germline pathogenic variant have colonic adenomatous polyposis of unknown etiology (CPUE).

In a cross-sectional study of 3,789 patients with 10 or more colorectal polyps, patients underwent multigene panel testing for the following genes: APC, BMPR1A, CDH1, CHEK2, EPCAM, MLH1, MSH2, MSH6, MUTYH, PMS2, PTEN, SMAD4, STK11, and TP53. In this study, pathogenic variants were found in 5% of participants, regardless of the participant's age or polyp cohort.[589] GREM1, POLD1, and POLE were only evaluated in 2,353 patients because these genes were added to the multigene panel assay during the study period. The number of pathogenic variants in adenomatous polyposis genes decreased as participants increased in age in all polyp-count groups in the adenoma cohort. This, however, was not true for the nonpolyposis-related CRC genes. The prevalence of pathogenic variants in hamartomatous polyposis genes was high in the hamartoma cohort, regardless of polyp count (40% of participants had 10–19 polyps, 72.1% of participants had 20–99 polyps, and 50% of participants had 100 or more polyps). The study provides additional support for multigene panel testing in individuals with 10 or more colorectal polyps, given that more than 5% of patients had pathogenic variants in all age groups. For more information about genetic testing for polyposis, see the Genetic testing for FAP section.

NTHL1, POLE, POLD1, and GREM1 pathogenic variant testing is being incorporated into the multigene panel tests for CRC susceptibility (offered commercially with APC and MUTYH testing so a polyposis panel can be ordered up front for patients with oligopolyposis). There are minimal data on the optimal surveillance approach for individuals with germline pathogenic variants in NTHL1 (biallelic carriers only), POLE, or POLD1. It is presumed that CRC risk for these pathogenic variants is comparable to that seen in Lynch syndrome. Hence, some guidelines are endorsing early and frequent colonoscopic screening, similar to that which is conducted in Lynch syndrome patients.

Lastly, oligopolyposis with varying polyp histologies (e.g., adenomas, serrated, inflammatory, and hamartomatous polyps) has been reported in two small case series of individuals previously treated with chemotherapy and radiation therapy for a prior childhood malignancy.[590,591] This phenomenon, termed therapy-associated polyposis (TAP), may be an acquired, nonfamilial phenotype caused by prior antineoplastic therapy. TAP is on the differential diagnosis list when nonfamilial oligopolyposis is identified in individuals previously treated with chemotherapy and/or radiation therapy. Another recent study identified oligopolyposis fulfilling World Health Organization (WHO) criteria for serrated polyposis syndrome (SPS) in 6% of a cohort of 101 Hodgkin lymphoma survivors treated with prior chemotherapy and/or radiation therapy.[592] This finding suggests that Hodgkin lymphoma survivors may be a particularly important population in TAP.

### Polymerase Proofreading–Associated Polyposis (POLE and POLD1 Genes)

Pathogenic variants in related DNA polymerase genes, POLE and POLD1, have been described in families with oligopolyposis, CRC, and endometrial cancer. This condition is called polymerase proofreading–associated polyposis (PPAP).[593,594] PPAP is an autosomal dominant hereditary cancer syndrome, in which the main replicative DNA polymerases, POLE and POLD1, are unable to proofread newly synthesized DNA strands. Several other malignancies (including endometrial, ovarian, small bowel, and brain cancers), have also been described in POLE and POLD1 carriers. PPAP-associated tumors often present with an ultramutator phenotype characterized by mutational loads exceeding 100 variants per megabase. PPAP-associated cancers can be highly responsive to immune checkpoint inhibitor therapy, irrespective of MSI/MMR status.[595,596] Identifying POLE and POLD1 carriers can be challenging since all known, putative, causal POLE and POLD1 variants are exonuclease-domain missense variants, which are notoriously difficult to classify. In addition, studies on the prevalence and penetrance of PPAP are limited, since this condition is rare, and risk estimates may be subject to ascertainment bias.

The prevalence of POLE and POLD1 pathogenic variants was determined in a prospective cohort of 2,309 unrelated patients with hereditary cancer. These patients all underwent genetic testing with a multigene hereditary cancer panel, in which PPAP was responsible for 0.1% to 0.4% of familial cancer cases (and reaching 0.3% to 0.7% when only CRC and polyposis were considered).[597] The tumors most commonly associated with PPAP included CRC, endometrial cancer, and ovarian cancer.

While PPAP is rare, the age-specific cumulative risks (penetrance) of CRC for POLE and POLD carriers is important to quantify and update, in order to better guide and optimize clinical management. In a retrospective study in which families with POLE or POLD1 pathogenic variants were identified via a PubMed search of relevant studies (prior to 2016) and genotypic data from 669 population-based CRC cases diagnosed in patients under 60 (from the Australasian Colorectal Cancer Family Registry), age-specific cumulative risks were estimated using modified segregation analyses.[598] Sixty-seven CRCs were identified in 364 first-degree relatives (FDRs) and second-degree relatives (SDRs) in 41 POLE families, and 6 CRCs were identified in 69 relatives from 9 POLD1 families. CRC risk to age 70 years for males and females, respectively, was 40% (95% CI, 26%–57%) and 32% (95% CI, 20%–47%) in POLE carriers and 63% (95% CI, 15%–99%) and 52% (95% CI, 11%–99%) in POLD1 carriers. CRC risk for POLE carriers was high enough to consider annual colonoscopy screening and the possible implementation of management guidelines similar to those used in Lynch syndrome. The authors concluded that clinical management recommendations for POLD1 carriers could be similar to those used in POLE carriers, but refinement of POLD1 CRC risk estimates (from larger cohorts) are needed to further refine recommendations.

Lifetime risk estimates of CRC in POLE carriers were higher than expected in a subsequent study of 354 individuals with early-onset/familial CRC (n = 218) and/or attenuated adenomatous polyposis (n = 136) at a single center between 2014 and 2017.[599] In 51 POLE carriers (from 10 families), risk estimates for CRC and extracolonic PPAP-associated cancers were calculated using nonparametric methods (based on a survival analysis approach) to account for unknown genotypes in relatives. Risks of CRC at ages 30 years, 50 years, and 70 years were 11.1% (95% CI, 4.2–17.5), 48.5% (96% CI, 33.2–60.3), and 74% (95% CI, 51.6–86.1), respectively. These risk estimates were similar in both men and women. These results provided additional support for frequent CRC surveillance in POLE carriers, similar to the surveillance used in highly penetrant Lynch syndrome genotypes. Extracolonic cancers like glioblastoma, small bowel cancer, endometrial cancer, and ovarian cancer were observed at low frequencies, limiting the ability to establish screening recommendations for these cancer types.

In POLD1 and POLE carriers, NCCN recommends high-quality colonoscopy starting at age 25 to 30 years. Colonoscopy screening can also begin 2 to 5 years before the earliest CRC in the family, if the CRC was diagnosed before age 25 years. Afterwards, colonoscopy is repeated every 1 to 2 years if polyps are identified or every 2 to 3 years if polyps are not identified.[123] There is insufficient evidence to provide recommendations on extracolonic cancer prevention for patients with variants in these genes.

### NTHL1-Associated Polyposis

NTHL1-associated polyposis (or NTHL1 tumor syndrome) was first described in 2015. A study used whole-exome sequencing in 51 individuals (from 48 families) with multiple colonic adenomas.[600] This study found homozygous germline nonsense pathogenic variants in NTHL1 (a base-excision repair gene) in seven affected individuals from three unrelated families. These individuals had CRC and multiple adenomas (8–50 adenomas). None of the adenomas were hyperplastic or serrated. Three affected females also had endometrial cancer or endometrial complex hyperplasia. One individual developed duodenal adenomas, and another individual developed duodenal cancer. All pedigrees were consistent with autosomal recessive inheritance. Three cancers and five adenomas from different affected individuals did not show MSI. These neoplasms did show enrichment of cytosine to thymine transitions.

A subsequent study of 863 families with CRC and 1,600 families without CRC confirmed an association between biallelic NTHL1 pathogenic variants and inherited CRC risk.[601]

In a systematic review of 21 papers, the phenotypic and genotypic spectrum of NTHL1 tumor syndrome, including the occurrence of both benign and malignant tumors, were reported in both biallelic and monoallelic carriers.[602]

- In 47 patients with biallelic pathogenic variants (from 32 families), 23 (49%) were diagnosed with CRC (mean age, 55 y; range, 31–73 y). In addition, 12 of the 22 female patients (55%) were diagnosed with breast cancer (mean age, 49 y; range, 36–63 y). In those who underwent colonoscopy, 93% had colonic adenomas ranging from 2 to 150 polyps, and three patients (6%) had duodenal adenomatosis. Overall, 37 carriers (79%) had at least one primary cancer (cancers occurred in different organs). All ten patients without cancer diagnoses had colonic adenomas. Six female patients (27%) also had gynecological cancers (four patients had endometrial cancer, one patient had ovarian cancer, and one patient had cervical cancer).
- In 158 patients with monoallelic germline NTHL1 variants, 29 individuals (18%) were diagnosed with CRC (mean age, 56 y; range, 36–75 y). Twenty-six out of 68 (38%) monoallelic carriers who underwent colonoscopy had colon polyps or adenomas (1–70 polyps or adenomas). Six patients had more than ten adenomas or polyps. Breast cancer was diagnosed in 59 out of 120 (49%) female monoallelic carriers (mean age, 50 y; range, 24–79 y).
- Limitations of this review included the following: (1) CRC and breast cancer may have been overrepresented due to ascertainment bias; (2) there may have been overlap with other germline pathogenic variants (one Lynch syndrome case and three BRCA2 cases were included in analyses of monoallelic NTHL1 carriers with breast cancer); (3) available data were inconsistent in studies involving monoallelic NTHL1 carriers.

Based on these results, the authors concluded that early endoscopic CRC surveillance can start before age 30 years in biallelic NTHL1 carriers, similar to the surveillance used in MUTYH carriers.[602] Given inconsistent reporting on duodenal polyposis and cancer in biallelic NTHL1 carriers, estimated duodenal neoplasia risk remains unclear, and upper GI tract surveillance could likely be postponed to the third or fourth decade of life. In addition, annual mammography or breast MRI can begin at age 40 years. However, this surveillance can begin at an earlier age if there is a young breast cancer diagnosis in the family. Gynecologic examination with TVUS can be considered every other year, starting at age 40 years.

Consistent with prior reports, monoallelic NTHL1 carriers do not have significantly increased cancer risk. It is not recommended, that these individuals undergo intensive cancer surveillance for GI, breast, or gynecologic cancers.

### AXIN2-Related Polyposis

Pathogenic variants in AXIN2, a gene encoding a protein that forms part of the beta-catenin destruction complex, have been associated with oligodontia, ectodermal dysplasia, colorectal polyposis, and CRC in populations enriched with polyposis and CRC.[603,604] The beta-catenin destruction complex consists of several proteins, including AXIN2, and it downregulates beta-catenin, a transcriptional coactivator of Wnt-targeted gene expression.

The prevalence of AXIN2 pathogenic variants and their contribution to both colorectal polyposis and CRC remains unclear. An AXIN2 pathogenic variant was first implicated in a Finnish family (with multiple members) who had oligodontia (absence of >6 nonwisdom teeth in family members), CRC, and polyposis with autosomal dominant inheritance.[605] Subsequent reports had similar results, with other manifestations that included variable penetrance and ectodermal dysplasia (i.e., little hair and eyebrows).[606,607] Affected individuals with AXIN2 pathogenic variants from eight families in Australia/New Zealand were identified based on personal histories of unexplained colonic polyposis (presented with 10 to >100 colorectal polyps) and multiple CRC cases.[603] Similarly, 10 out of 11 French individuals with ten different AXIN2 pathogenic variants were ascertained based on histories of colorectal polyposis or CRC diagnosed at young ages. These individuals presented with adenomatous, serrated, and hyperplastic polyposis by a mean age of 55 years.[604] In three populations, extracolonic cancers included breast cancer, ampullary cancer, ovarian cancer, and melanoma. Multiple cases of tooth agenesis and ectodermal dysplasia (such as sparse hair and eyebrows) were frequently reported.[603,604]

In AXIN2 carriers, NCCN recommends the initiation of high-quality colonoscopy at age 25 to 30 years. Colonoscopy can be repeated every 2 to 3 years if polyps are not identified or every 1 to 2 years if polyps are found. Surgery can be considered in cases with unmanageable polyposis.[123] Given the lack of penetrance data for extracolonic cancers, no further recommendations are provided for AXIN2 carriers.

### Hereditary Mixed Polyposis Syndrome (GREM1 Gene)

HMPS is a rare hereditary cancer syndrome characterized by the development of various types of colon polyps including serrated adenomas, atypical juvenile polyps, adenomas, and colonic adenocarcinoma. A small number of individuals/families with HMPS harbor a large, 40-kb, single-copy germline duplication upstream of gremlin 1 (GREM1)—the gene that is thought to cause the HMPS phenotype and increased CRC risk.[608]

Germline GREM1 pathogenic duplications have been observed primarily in individuals/families of Ashkenazi Jewish descent, with varying clinical presentations. Although polyposis appears to be a unifying feature in most families with this duplication, there is a high degree of variability with respect to polyp number, histology, and age of onset. In addition, extracolonic malignancies have been described in several GREM1 pathogenic variant carriers, although the small number of affected individuals limits the ability to definitively demonstrate a causal link to the GREM1 pathogenic variant.

Evidence-based strategies for managing individuals with germline GREM1 pathogenic duplications do not yet exist. However, NCCN guidelines recommend that GREM1 carriers initiate colonoscopic surveillance between ages 25 and 30 years.[123] Colonoscopy is repeated every 2 to 3 years if polyps are not identified or every 1 to 2 years if polyps are identified.

### CHEK2

Several studies have suggested that germline CHEK2 pathogenic variants may confer increased risks of colorectal cancer.[609-611] CHEK2 pathogenic variants have been seen in up to 2% of individuals with CRC.[612] However, data have suggested that CHEK2 variants are associated with, at most, a modestly increased risk of CRC (i.e., low penetrance).[613] Two large retrospective studies of CHEK2 cases ascertained from two genetic testing laboratories did not find an increased risk of CRC in CHEK2 carriers.[614,615] In fact, one study found that individuals with germline CHEK2 pathogenic variants had lower risks of CRC when compared with those who had negative results on germline genetic testing panels.[614]

NCCN guidelines recommend that individuals with germline CHEK2 pathogenic variants (and no other CRC risk factors) participate in general population screening for CRC.[123] When a CHEK2 carrier has additional CRC risk factors (e.g., personal/family history of CRC, personal history of colorectal adenomas), the timing and frequency of surveillance colonoscopies is typically determined by the individual's clinical history.

For more information, see the CHEK2 section in Genetics of Breast and Gynecologic Cancers.

### Serrated Polyposis Syndrome

The term serrated polyposis syndrome (SPS) has been used to characterize individuals who have mostly sessile serrated polyps/lesions (SSPs/SSLs) in the large intestine. Although the term syndrome is used in SPS, most cases appear to be nonfamilial, and the underlying etiology of these polyps is typically unidentifiable.

Germline evaluation of individuals with serrated polyposis is typically unrevealing.[616-620] Rarely, germline RNF43 pathogenic variants are found in families with serrated polyposis.[621-623] Occasional MUTYH biallelic pathogenic variants and Lynch syndrome pathogenic variants have been found in patients with serrated polyps or features of serrated polyposis.

The WHO states that an individual meets SPS diagnostic criteria if either of the following criteria are fulfilled:[624]

- A personal history of at least five histologically diagnosed serrated lesions (this includes hyperplastic polyps, SSPs, or SSLs) that are all 5 mm or larger, occurring proximal to the rectum. At least two of these polyps/lesions must be 10 mm or larger.
- A personal history of 20 or more serrated lesions (of any size) in the colon/rectum, with 5 or more lesions occurring proximal to the rectum.

Studies have shown that colorectal adenocarcinoma incidence in patients who met formally defined diagnostic criteria for SPS range from 19.9% to greater than 50%.[625-633] A small fraction (<5%) of individuals who fulfill SPS diagnostic criteria harbor germline RNF43 pathogenic variants. Clinical germline genetic testing can be offered to those who meet SPS diagnostic criteria, especially if there is a concomitant family history of CRC and/or SSPs/SSLs.[621-623] While only a small fraction of SPS cases are attributable to monogenic inherited risk, data have suggested that FDRs of individuals with SPS are at increased risk of CRC. Lifestyle factors like smoking, alcohol use, and increased body mass index were associated with SPS in case-control data.[634]

In some individuals with therapy-associated polyposis (TAP), an acquired, mixed-histology form of colorectal and GI tract oligopolyposis, polyps can be seen in childhood/young-adult cancer survivors who were treated with chemotherapy and/or radiotherapy. Some of these individuals will have clinical histories that fulfill SPS diagnostic criteria.[635,636] For more information, see the Oligopolyposis section.

Evidence-based management guidelines for individuals with SPS do not yet exist. NCCN guidelines recommend undergoing high-quality colonoscopy to clear all SSPs/SSLs that are 5 mm or larger (after the SPS phenotype is clinically identified in an individual).[123] Then, colonoscopy is repeated every 1 to 3 years, depending on the number and size of polyps.

### MBD4

MBD4-associated neoplasia syndrome is associated with an increased risk of GI polyposis (comparable to AFAP). For more information, see MBD4-Associated Neoplasia Syndrome.

### Advances in Endoscopic Imaging in Hereditary CRC

Performance of endoscopic therapies for adenomas in FAP and Lynch syndrome, and decision-making regarding surgical referral and planning, require accurate estimates of the presence of adenomas. In both AFAP and Lynch syndrome the presence of very subtle adenomas poses special challenges—microadenomas in the case of AFAP and flat, though sometimes large, adenomas in Lynch syndrome.

#### Chromoendoscopy

The need for sensitive means to endoscopically detect subtle polyps has increased with the recognition of flat adenomas and sessile serrated polyps in otherwise average-risk subjects, very attenuated adenoma phenotypes in AFAP, and subtle flat adenomas in Lynch syndrome. Modern high-resolution endoscopes improve adenoma detection yield, but the use of various vital dyes, especially indigo carmine dye-spray, has further improved detection. Several studies have shown that the improved mucosal contrast achieved with the use of indigo carmine can improve the adenoma detection rate. Whether family history is significant or not, careful clinical evaluation consisting of dye-spray colonoscopy (indigo carmine or methylene blue),[474,637-642] with or without magnification, or possibly newer imaging techniques such as narrow-band imaging,[643] may reveal the characteristic right-sided clustering of more numerous microadenomas. Upper GI endoscopy may be informative if duodenal adenomas or fundic gland polyps with surface dysplasia are found. Such findings will increase the likelihood of variant detection if APC or MUTYH testing is pursued.

In various large series of average-risk populations, subtle flat lesions were detected in about 5% to 10% of cases, including adenomas with high-grade dysplasia and invasive adenocarcinoma.[644] Some of these studies involved tandem procedures—white-light exam followed by randomization to “intensive” (> 20-minute pull-back from cecum) inspection versus chromoendoscopy—with significantly more adenomas detected in the chromoendoscopy group.[645] However, in several randomized trials, no significant difference in yield was seen.[646,647]

In a randomized trial of subjects with Lynch syndrome,[648] standard colonoscopy, with polypectomy as indicated, was followed by either indigo carmine chromoendoscopy or repeat “intensive” white-light colonoscopy (a design very nearly identical to the average-risk screening group noted above). In this series, no significant difference in adenoma yield between the chromoendoscopy and intensive white-light groups was detected. However, these patients were younger and, in many cases, had undergone several previous exams that might have resulted in polyp clearing.

In a German study,[649] one series of Lynch syndrome patients underwent white-light exam followed by chromoendoscopy, while a second series underwent colonoscopy with narrow-band imaging followed by chromoendoscopy. Significant differences in flat polyp detection favored chromoendoscopy in both series, although some of the detected lesions were hyperplastic. In a French series of Lynch syndrome subjects that also employed white-light exam followed by chromoendoscopy, significantly more adenomas were detected with chromoendoscopy.[475]

Fewer evaluations of chromoendoscopy have been performed in AFAP than in Lynch syndrome. One study examined four patients with presumed AFAP and fewer than 20 adenomas upon white-light examination.[650] All had more than 1,000 diminutive adenomas found on chromoendoscopy, in agreement with pathology evaluation after colectomy.

A similar role for chromoendoscopy has been suggested to evaluate the duodenum in FAP. One study from Holland that used indigo carmine dye-spray to detect duodenal adenomas showed an increase in the number and size of adenomas, including some large ones. Overall Spigelman score was not significantly affected.[651]

#### Small bowel imaging

Patients with PJS and JPS are at greater risk of disease-related complications in the small bowel (e.g., bleeding, obstruction, intussusception, or cancer). FAP patients, although at great risk of duodenal neoplasia, have a relatively low risk of jejunoileal involvement. The RR of small bowel malignancy is very high in Lynch syndrome, but absolute risk is less than 10%. Although the risks of small bowel neoplasia are high enough to warrant consideration of surveillance in each disease, the technical challenges of doing so have been daunting. Because of the technical challenges and relatively low prevalences, there is virtually no evidence base for small-bowel screening in Lynch syndrome.

Historically, the relative endoscopic inaccessibility of the mid and distal small bowel required radiographic measures for its evaluation, including the barium small bowel series or a variant called tube enteroclysis, in which a nasogastroduodenal tube is placed so that all of the contrast goes into the small intestine quickly and undiluted by gastric juice for more precise imaging. None of these measures were sensitive for small lesions. Previously, therapeutic removal of lesions required laparotomy. However, multiple novel endoscopic approaches have been developed to overcome the technical limitations of small bowel endoscopy, which has enabled jejunal and ileal access for purposes of polypectomy.

For patients with PJS, double-balloon endoscopy or other forms of deep enteroscopy (single-balloon overtube or spiral overtube) are the preferred methods for evaluation of the small bowel.[652] This may involve either peroral enteroscopy or retrograde enteroscopy to achieve more complete evaluation of the small bowel. Because these procedures are time-consuming and involve risks of complication, deep enteroscopy is usually preceded by more imaging, including barium exams, capsule endoscopy, CT or magnetic resonance enterography.[73]

In FAP, data from capsule endoscopy [73] show a 50% to 100% prevalence of jejunal and/or ileal polyps in patients with Spigelman stage III or stage IV duodenal involvement but virtually no such polyps in Spigelman stage I or stage II disease. Polyps smaller than 10 mm and were not biopsied or removed. Consequently, their clinical significance remains uncertain but is likely limited, given the infrequency of jejunoileal cancer reports in FAP.

Capsule endoscopy in the small series of PJS patients described above [73] showed the presence of a similar frequency (50%–100%) of polyps, but the prevalent polyps were much larger than in FAP, were more likely to become symptomatic, and warranted endoscopic or surgical excision. Capsule studies were suggested as an appropriate replacement for radiographic studies because of the sensitivity of capsule endoscopy.

### References

Bussey HJ: Familial Polyposis Coli: Family Studies, Histopathology, Differential Diagnosis, and Results of Treatment. The Johns Hopkins University Press, 1975.
Burt RW, Leppert MF, Slattery ML, et al.: Genetic testing and phenotype in a large kindred with attenuated familial adenomatous polyposis. Gastroenterology 127 (2): 444-51, 2004.15300576
Choi YH, Cotterchio M, McKeown-Eyssen G, et al.: Penetrance of colorectal cancer among MLH1/MSH2 carriers participating in the colorectal cancer familial registry in Ontario. Hered Cancer Clin Pract 7 (1): 14, 2009.19698169
Bonadona V, Bonaïti B, Olschwang S, et al.: Cancer risks associated with germline mutations in MLH1, MSH2, and MSH6 genes in Lynch syndrome. JAMA 305 (22): 2304-10, 2011.21642682
Møller P, Seppälä T, Bernstein I, et al.: Cancer incidence and survival in Lynch syndrome patients receiving colonoscopic and gynaecological surveillance: first report from the prospective Lynch syndrome database. Gut 66 (3): 464-472, 2017.26657901
Baglietto L, Lindor NM, Dowty JG, et al.: Risks of Lynch syndrome cancers for MSH6 mutation carriers. J Natl Cancer Inst 102 (3): 193-201, 2010.20028993
Aretz S, Uhlhaas S, Goergens H, et al.: MUTYH-associated polyposis: 70 of 71 patients with biallelic mutations present with an attenuated or atypical phenotype. Int J Cancer 119 (4): 807-14, 2006.16557584
Hearle N, Schumacher V, Menko FH, et al.: Frequency and spectrum of cancers in the Peutz-Jeghers syndrome. Clin Cancer Res 12 (10): 3209-15, 2006.16707622
Coburn MC, Pricolo VE, DeLuca FG, et al.: Malignant potential in intestinal juvenile polyposis syndromes. Ann Surg Oncol 2 (5): 386-91, 1995.7496832 96046973
Desai DC, Neale KF, Talbot IC, et al.: Juvenile polyposis. Br J Surg 82 (1): 14-7, 1995.7881943 95187747
Bülow S, Berk T, Neale K: The history of familial adenomatous polyposis. Fam Cancer 5 (3): 213-20, 2006.16998666
Herrera L, ed.: Familial Adenomatous Polyposis. Alan R. Liss Inc, 1990.
Bülow S: Familial polyposis coli. Dan Med Bull 34 (1): 1-15, 1987.3030666 87160971
Campbell WJ, Spence RA, Parks TG: Familial adenomatous polyposis. Br J Surg 81 (12): 1722-33, 1994.7827926
Inra JA, Steyerberg EW, Grover S, et al.: Racial variation in frequency and phenotypes of APC and MUTYH mutations in 6,169 individuals undergoing genetic testing. Genet Med 17 (10): 815-21, 2015.25590978
Giardiello FM, Offerhaus JG: Phenotype and cancer risk of various polyposis syndromes. Eur J Cancer 31A (7-8): 1085-7, 1995 Jul-Aug.7576997
Jagelman DG, DeCosse JJ, Bussey HJ: Upper gastrointestinal cancer in familial adenomatous polyposis. Lancet 1 (8595): 1149-51, 1988.2896968 88215823
Sturt NJ, Gallagher MC, Bassett P, et al.: Evidence for genetic predisposition to desmoid tumours in familial adenomatous polyposis independent of the germline APC mutation. Gut 53 (12): 1832-6, 2004.15542524
Lynch HT, Fitzgibbons R: Surgery, desmoid tumors, and familial adenomatous polyposis: case report and literature review. Am J Gastroenterol 91 (12): 2598-601, 1996.8946994 97102754
Bülow S, Björk J, Christensen IJ, et al.: Duodenal adenomatosis in familial adenomatous polyposis. Gut 53 (3): 381-6, 2004.14960520
Burt RW: Colon cancer screening. Gastroenterology 119 (3): 837-53, 2000.10982778
Galiatsatos P, Foulkes WD: Familial adenomatous polyposis. Am J Gastroenterol 101 (2): 385-98, 2006.16454848
Bisgaard ML, Bülow S: Familial adenomatous polyposis (FAP): genotype correlation to FAP phenotype with osteomas and sebaceous cysts. Am J Med Genet A 140 (3): 200-4, 2006.16411234
Petersen GM, Slack J, Nakamura Y: Screening guidelines and premorbid diagnosis of familial adenomatous polyposis using linkage. Gastroenterology 100 (6): 1658-64, 1991.1673441 91209730
Berk T, Cohen Z, Bapat B, et al.: Negative genetic test result in familial adenomatous polyposis: clinical screening implications. Dis Colon Rectum 42 (3): 307-10; discussion 310-2, 1999.10223748 99238264
Jagelman DG: Clinical management of familial adenomatous polyposis. Cancer Surv 8 (1): 159-67, 1989.2553257 90030244
Neale K, Ritchie S, Thomson JP: Screening of offspring of patients with familial adenomatous polyposis: the St. Mark's Hospital polyposis register experience. In: Herrera L, ed.: Familial Adenomatous Polyposis. Alan R. Liss Inc, 1990, pp 61-66.
Nusliha A, Dalpatadu U, Amarasinghe B, et al.: Congenital hypertrophy of retinal pigment epithelium (CHRPE) in patients with familial adenomatous polyposis (FAP); a polyposis registry experience. BMC Res Notes 7: 734, 2014.25326340
Chen CS, Phillips KD, Grist S, et al.: Congenital hypertrophy of the retinal pigment epithelium (CHRPE) in familial colorectal cancer. Fam Cancer 5 (4): 397-404, 2006.16944273
Coleman P, Barnard NA: Congenital hypertrophy of the retinal pigment epithelium: prevalence and ocular features in the optometric population. Ophthalmic Physiol Opt 27 (6): 547-55, 2007.17956359
Traboulsi EI, Apostolides J, Giardiello FM, et al.: Pigmented ocular fundus lesions and APC mutations in familial adenomatous polyposis. Ophthalmic Genet 17 (4): 167-74, 1996.9010867
Anthony T, Rodriguez-Bigas MA, Weber TK, et al.: Desmoid tumors. J Am Coll Surg 182 (4): 369-77, 1996.8605563 96195698
Eccles DM, van der Luijt R, Breukel C, et al.: Hereditary desmoid disease due to a frameshift mutation at codon 1924 of the APC gene. Am J Hum Genet 59 (6): 1193-201, 1996.8940264 97094176
Bertario L, Russo A, Sala P, et al.: Genotype and phenotype factors as determinants of desmoid tumors in patients with familial adenomatous polyposis. Int J Cancer 95 (2): 102-7, 2001.11241320 21135795
Lynch HT: Desmoid tumors: genotype-phenotype differences in familial adenomatous polyposis--a nosological dilemma. Am J Hum Genet 59 (6): 1184-5, 1996.8940262 97094174
Scott RJ, Froggatt NJ, Trembath RC, et al.: Familial infiltrative fibromatosis (desmoid tumours) (MIM135290) caused by a recurrent 3' APC gene mutation. Hum Mol Genet 5 (12): 1921-4, 1996.8968744 97123497
Caspari R, Olschwang S, Friedl W, et al.: Familial adenomatous polyposis: desmoid tumours and lack of ophthalmic lesions (CHRPE) associated with APC mutations beyond codon 1444. Hum Mol Genet 4 (3): 337-40, 1995.7795585 95315928
Davies DR, Armstrong JG, Thakker N, et al.: Severe Gardner syndrome in families with mutations restricted to a specific region of the APC gene. Am J Hum Genet 57 (5): 1151-8, 1995.7485167
Bertario L, Russo A, Sala P, et al.: Multiple approach to the exploration of genotype-phenotype correlations in familial adenomatous polyposis. J Clin Oncol 21 (9): 1698-707, 2003.12721244 22608055
Elayi E, Manilich E, Church J: Polishing the crystal ball: knowing genotype improves ability to predict desmoid disease in patients with familial adenomatous polyposis. Dis Colon Rectum 52 (10): 1762-6, 2009.19966610
Nieuwenhuis MH, Lefevre JH, Bülow S, et al.: Family history, surgery, and APC mutation are risk factors for desmoid tumors in familial adenomatous polyposis: an international cohort study. Dis Colon Rectum 54 (10): 1229-34, 2011.21904137
Clark SK, Smith TG, Katz DE, et al.: Identification and progression of a desmoid precursor lesion in patients with familial adenomatous polyposis. Br J Surg 85 (7): 970-3, 1998.9692575
Hodgson SV, Maher ER: Gastro-intestinal system. In: Hodgson SV, Maher ER: A Practical Guide to Human Cancer Genetics. 2nd ed. Cambridge University Press, 1999, pp 167-175.
Rodriguez-Bigas MA, Mahoney MC, Karakousis CP, et al.: Desmoid tumors in patients with familial adenomatous polyposis. Cancer 74 (4): 1270-4, 1994.7519966
Clark SK, Neale KF, Landgrebe JC, et al.: Desmoid tumours complicating familial adenomatous polyposis. Br J Surg 86 (9): 1185-9, 1999.10504375
Belchetz LA, Berk T, Bapat BV, et al.: Changing causes of mortality in patients with familial adenomatous polyposis. Dis Colon Rectum 39 (4): 384-7, 1996.8878496
Iwama T, Tamura K, Morita T, et al.: A clinical overview of familial adenomatous polyposis derived from the database of the Polyposis Registry of Japan. Int J Clin Oncol 9 (4): 308-16, 2004.15375708
Church J, Berk T, Boman BM, et al.: Staging intra-abdominal desmoid tumors in familial adenomatous polyposis: a search for a uniform approach to a troubling disease. Dis Colon Rectum 48 (8): 1528-34, 2005.15906134
Parc Y, Piquard A, Dozois RR, et al.: Long-term outcome of familial adenomatous polyposis patients after restorative coloproctectomy. Ann Surg 239 (3): 378-82, 2004.15075655
Church JM, McGannon E, Hull-Boiner S, et al.: Gastroduodenal polyps in patients with familial adenomatous polyposis. Dis Colon Rectum 35 (12): 1170-3, 1992.1335405 93114188
Sarre RG, Frost AG, Jagelman DG, et al.: Gastric and duodenal polyps in familial adenomatous polyposis: a prospective study of the nature and prevalence of upper gastrointestinal polyps. Gut 28 (3): 306-14, 1987.3032754 87192200
Watanabe H, Enjoji M, Yao T, et al.: Gastric lesions in familial adenomatosis coli: their incidence and histologic analysis. Hum Pathol 9 (3): 269-83, 1978.26633
Weston BR, Helper DJ, Rex DK: Positive predictive value of endoscopic features deemed typical of gastric fundic gland polyps. J Clin Gastroenterol 36 (5): 399-402, 2003 May-Jun.12702980
Abraham SC, Nobukawa B, Giardiello FM, et al.: Fundic gland polyps in familial adenomatous polyposis: neoplasms with frequent somatic adenomatous polyposis coli gene alterations. Am J Pathol 157 (3): 747-54, 2000.10980114
Odze RD, Marcial MA, Antonioli D: Gastric fundic gland polyps: a morphological study including mucin histochemistry, stereometry, and MIB-1 immunohistochemistry. Hum Pathol 27 (9): 896-903, 1996.8816883
Wu TT, Kornacki S, Rashid A, et al.: Dysplasia and dysregulation of proliferation in foveolar and surface epithelia of fundic gland polyps from patients with familial adenomatous polyposis. Am J Surg Pathol 22 (3): 293-8, 1998.9500770
Burt RW: Gastric fundic gland polyps. Gastroenterology 125 (5): 1462-9, 2003.14598262
Bianchi LK, Burke CA, Bennett AE, et al.: Fundic gland polyp dysplasia is common in familial adenomatous polyposis. Clin Gastroenterol Hepatol 6 (2): 180-5, 2008.18237868
Jalving M, Koornstra JJ, Wesseling J, et al.: Increased risk of fundic gland polyps during long-term proton pump inhibitor therapy. Aliment Pharmacol Ther 24 (9): 1341-8, 2006.17059515
Leggett B: FAP: another indication to treat H pylori. Gut 51 (4): 463-4, 2002.12235061
Nakamura S, Matsumoto T, Kobori Y, et al.: Impact of Helicobacter pylori infection and mucosal atrophy on gastric lesions in patients with familial adenomatous polyposis. Gut 51 (4): 485-9, 2002.12235068
Iida M, Yao T, Itoh H, et al.: Natural history of gastric adenomas in patients with familial adenomatosis coli/Gardner's syndrome. Cancer 61 (3): 605-11, 1988.3338026
Bülow S, Alm T, Fausa O, et al.: Duodenal adenomatosis in familial adenomatous polyposis. DAF Project Group. Int J Colorectal Dis 10 (1): 43-6, 1995.7745323
Park JG, Park KJ, Ahn YO, et al.: Risk of gastric cancer among Korean familial adenomatous polyposis patients. Report of three cases. Dis Colon Rectum 35 (10): 996-8, 1992.1327683
Iwama T, Mishima Y, Utsunomiya J: The impact of familial adenomatous polyposis on the tumorigenesis and mortality at the several organs. Its rational treatment. Ann Surg 217 (2): 101-8, 1993.8382467
Offerhaus GJ, Giardiello FM, Krush AJ, et al.: The risk of upper gastrointestinal cancer in familial adenomatous polyposis. Gastroenterology 102 (6): 1980-2, 1992.1316858 92267299
Brosens LA, Keller JJ, Offerhaus GJ, et al.: Prevention and management of duodenal polyps in familial adenomatous polyposis. Gut 54 (7): 1034-43, 2005.15951555
Ngamruengphong S, Boardman LA, Heigh RI, et al.: Gastric adenomas in familial adenomatous polyposis are common, but subtle, and have a benign course. Hered Cancer Clin Pract 12 (1): 4, 2014.24565534
Mankaney G, Leone P, Cruise M, et al.: Gastric cancer in FAP: a concerning rise in incidence. Fam Cancer 16 (3): 371-376, 2017.28185118
Li J, Woods SL, Healey S, et al.: Point Mutations in Exon 1B of APC Reveal Gastric Adenocarcinoma and Proximal Polyposis of the Stomach as a Familial Adenomatous Polyposis Variant. Am J Hum Genet 98 (5): 830-842, 2016.27087319
Perzin KH, Bridge MF: Adenomas of the small intestine: a clinicopathologic review of 51 cases and a study of their relationship to carcinoma. Cancer 48 (3): 799-819, 1981.7248908 81234215
Ranzi T, Castagnone D, Velio P, et al.: Gastric and duodenal polyps in familial polyposis coli. Gut 22 (5): 363-7, 1981.7250748 81237854
Burke CA, Santisi J, Church J, et al.: The utility of capsule endoscopy small bowel surveillance in patients with polyposis. Am J Gastroenterol 100 (7): 1498-502, 2005.15984971
Tescher P, Macrae FA, Speer T, et al.: Surveillance of FAP: a prospective blinded comparison of capsule endoscopy and other GI imaging to detect small bowel polyps. Hered Cancer Clin Pract 8 (1): 3, 2010.20361877
Eliakim R: Video capsule endoscopy of the small bowel. Curr Opin Gastroenterol 26 (2): 129-33, 2010.20145540
Taylor SA, Halligan S, Moore L, et al.: Multidetector-row CT duodenography in familial adenomatous polyposis: a pilot study. Clin Radiol 59 (10): 939-45, 2004.15451356
Vasen HF, Bülow S, Myrhøj T, et al.: Decision analysis in the management of duodenal adenomatosis in familial adenomatous polyposis. Gut 40 (6): 716-9, 1997.9245923 97388690
Groves CJ, Saunders BP, Spigelman AD, et al.: Duodenal cancer in patients with familial adenomatous polyposis (FAP): results of a 10 year prospective study. Gut 50 (5): 636-41, 2002.11950808 21947761
Aparicio T, Henriques J, Manfredi S, et al.: Small bowel adenocarcinoma: Results from a nationwide prospective ARCAD-NADEGE cohort study of 347 patients. Int J Cancer 147 (4): 967-977, 2020.31912484
Bleau BL, Gostout CJ: Endoscopic treatment of ampullary adenomas in familial adenomatous polyposis. J Clin Gastroenterol 22 (3): 237-41, 1996.8724267 96320876
Norton ID, Gostout CJ: Management of periampullary adenoma. Dig Dis 16 (5): 266-73, 1998 Sep-Oct.9892786 99110743
Norton ID, Gostout CJ, Baron TH, et al.: Safety and outcome of endoscopic snare excision of the major duodenal papilla. Gastrointest Endosc 56 (2): 239-43, 2002.12145603 22140173
Saurin JC, Gutknecht C, Napoleon B, et al.: Surveillance of duodenal adenomas in familial adenomatous polyposis reveals high cumulative risk of advanced disease. J Clin Oncol 22 (3): 493-8, 2004.14752072
Spigelman AD, Williams CB, Talbot IC, et al.: Upper gastrointestinal cancer in patients with familial adenomatous polyposis. Lancet 2 (8666): 783-5, 1989.2571019
Thiruvengadam SS, Lopez R, O'Malley M, et al.: Spigelman stage IV duodenal polyposis does not precede most duodenal cancer cases in patients with familial adenomatous polyposis. Gastrointest Endosc 89 (2): 345-354.e2, 2019.30081000
Cetta F, Montalto G, Gori M, et al.: Germline mutations of the APC gene in patients with familial adenomatous polyposis-associated thyroid carcinoma: results from a European cooperative study. J Clin Endocrinol Metab 85 (1): 286-92, 2000.10634400
Cetta F, Curia MC, Montalto G, et al.: Thyroid carcinoma usually occurs in patients with familial adenomatous polyposis in the absence of biallelic inactivation of the adenomatous polyposis coli gene. J Clin Endocrinol Metab 86 (1): 427-32, 2001.11232035
Seki M, Tanaka K, Kikuchi-Yanoshita R, et al.: Loss of normal allele of the APC gene in an adrenocortical carcinoma from a patient with familial adenomatous polyposis. Hum Genet 89 (3): 298-300, 1992.1351034
Marchesa P, Fazio VW, Church JM, et al.: Adrenal masses in patients with familial adenomatous polyposis. Dis Colon Rectum 40 (9): 1023-8, 1997.9293929
Kallenberg FGJ, Bastiaansen BAJ, Nio CY, et al.: Adrenal Lesions in Patients With (Attenuated) Familial Adenomatous Polyposis and MUTYH-Associated Polyposis. Dis Colon Rectum 60 (10): 1057-1064, 2017.28891849
Cetta F, Mazzarella L, Bon G, et al.: Genetic alterations in hepatoblastoma and hepatocellular carcinoma associated with familial adenomatous polyposis. Med Pediatr Oncol 41 (5): 496-7, 2003.14515405
Young J, Barker M, Robertson T, et al.: A case of myoepithelial carcinoma displaying biallelic inactivation of the tumour suppressor gene APC in a patient with familial adenomatous polyposis. J Clin Pathol 55 (3): 230-1, 2002.11896079
Cetta F, Montalto G, Petracci M: Hepatoblastoma and APC gene mutation in familial adenomatous polyposis. Gut 41 (3): 417, 1997.9378405
Giardiello FM, Petersen GM, Brensinger JD, et al.: Hepatoblastoma and APC gene mutation in familial adenomatous polyposis. Gut 39 (96): 867-9, 1996.9038672
Ding SF, Michail NE, Habib NA: Genetic changes in hepatoblastoma. J Hepatol 20 (5): 672-5, 1994.8071546
Hughes LJ, Michels VV: Risk of hepatoblastoma in familial adenomatous polyposis. Am J Med Genet 43 (6): 1023-5, 1992.1329510
Bernstein IT, Bülow S, Mauritzen K: Hepatoblastoma in two cousins in a family with adenomatous polyposis. Report of two cases. Dis Colon Rectum 35 (4): 373-4, 1992.1316263
Giardiello FM, Offerhaus GJ, Krush AJ, et al.: Risk of hepatoblastoma in familial adenomatous polyposis. J Pediatr 119 (5): 766-8, 1991.1658283
Perilongo G: Link confirmed between FAP and hepatoblastoma. Oncology (Huntingt) 5 (7): 14, 1991.1662980
Toyama WM, Wagner S: Hepatoblastoma with familial polyposis coli: another case and corrected pedigree. Surgery 108 (1): 123-4, 1990.2163118
Kurahashi H, Takami K, Oue T, et al.: Biallelic inactivation of the APC gene in hepatoblastoma. Cancer Res 55 (21): 5007-11, 1995.7585543
Hirschman BA, Pollock BH, Tomlinson GE: The spectrum of APC mutations in children with hepatoblastoma from familial adenomatous polyposis kindreds. J Pediatr 147 (2): 263-6, 2005.16126064
Hamilton SR, Liu B, Parsons RE, et al.: The molecular basis of Turcot's syndrome. N Engl J Med 332 (13): 839-47, 1995.7661930 95174843
Laurent-Puig P, Béroud C, Soussi T: APC gene: database of germline and somatic mutations in human tumors and cell lines. Nucleic Acids Res 26 (1): 269-70, 1998.9399850 98062443
Yan H, Dobbie Z, Gruber SB, et al.: Small changes in expression affect predisposition to tumorigenesis. Nat Genet 30 (1): 25-6, 2002.11743581 21624593
Spirio L, Olschwang S, Groden J, et al.: Alleles of the APC gene: an attenuated form of familial polyposis. Cell 75 (5): 951-7, 1993.8252630 94073973
Brensinger JD, Laken SJ, Luce MC, et al.: Variable phenotype of familial adenomatous polyposis in pedigrees with 3' mutation in the APC gene. Gut 43 (4): 548-52, 1998.9824584 99071229
Soravia C, Berk T, Madlensky L, et al.: Genotype-phenotype correlations in attenuated adenomatous polyposis coli. Am J Hum Genet 62 (6): 1290-301, 1998.9585611 98254449
Pedemonte S, Sciallero S, Gismondi V, et al.: Novel germline APC variants in patients with multiple adenomas. Genes Chromosomes Cancer 22 (4): 257-67, 1998.9669663 98332326
Rozen P, Samuel Z, Shomrat R, et al.: Notable intrafamilial phenotypic variability in a kindred with familial adenomatous polyposis and an APC mutation in exon 9. Gut 45 (6): 829-33, 1999.10562580
Fearnhead NS: Familial adenomatous polyposis and MYH. Lancet 362 (9377): 5-6, 2003.12853190
Al-Tassan N, Chmiel NH, Maynard J, et al.: Inherited variants of MYH associated with somatic G:C-->T:A mutations in colorectal tumors. Nat Genet 30 (2): 227-32, 2002.11818965
Bellido F, Pineda M, Aiza G, et al.: POLE and POLD1 mutations in 529 kindred with familial colorectal cancer and/or polyposis: review of reported cases and recommendations for genetic testing and surveillance. Genet Med 18 (4): 325-32, 2016.26133394
Spier I, Holzapfel S, Altmüller J, et al.: Frequency and phenotypic spectrum of germline mutations in POLE and seven other polymerase genes in 266 patients with colorectal adenomas and carcinomas. Int J Cancer 137 (2): 320-31, 2015.25529843
Bakry D, Aronson M, Durno C, et al.: Genetic and clinical determinants of constitutional mismatch repair deficiency syndrome: report from the constitutional mismatch repair deficiency consortium. Eur J Cancer 50 (5): 987-96, 2014.24440087
Grover S, Kastrinos F, Steyerberg EW, et al.: Prevalence and phenotypes of APC and MUTYH mutations in patients with multiple colorectal adenomas. JAMA 308 (5): 485-92, 2012.22851115
Sieber OM, Lamlum H, Crabtree MD, et al.: Whole-gene APC deletions cause classical familial adenomatous polyposis, but not attenuated polyposis or "multiple" colorectal adenomas. Proc Natl Acad Sci U S A 99 (5): 2954-8, 2002.11867715 21874093
Michils G, Tejpar S, Thoelen R, et al.: Large deletions of the APC gene in 15% of mutation-negative patients with classical polyposis (FAP): a Belgian study. Hum Mutat 25 (2): 125-34, 2005.15643602
Kadiyska TK, Todorov TP, Bichev SN, et al.: APC promoter 1B deletion in familial polyposis--implications for mutation-negative families. Clin Genet 85 (5): 452-7, 2014.23725351
Jasperson KW, Patel SG, Ahnen DJ, et al., eds.: APC-Associated Polyposis Conditions. In: Adam MP, Feldman J, Mirzaa GM, et al., eds.: GeneReviews. University of Washington, Seattle, 1993-2024, pp. Available online. (https://www.ncbi.nlm.nih.gov/pubmed/?term=20301519) Last accessed May 24, 2024.
Bisgaard ML, Fenger K, Bülow S, et al.: Familial adenomatous polyposis (FAP): frequency, penetrance, and mutation rate. Hum Mutat 3 (2): 121-5, 1994.8199592
Patenaude AF: Cancer susceptibility testing: risks, benefits, and personal beliefs. In: Clarke A, ed.: The Genetic Testing of Children. BIOS Scientific, 1998, pp 145-156.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal, Endometrial, and Gastric. Version 3.2024. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2024. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_ceg.pdf) Last accessed December 13, 2024.
Nugent KP, Spigelman AD, Phillips RK: Life expectancy after colectomy and ileorectal anastomosis for familial adenomatous polyposis. Dis Colon Rectum 36 (11): 1059-62, 1993.8223060
Barrow P, Khan M, Lalloo F, et al.: Systematic review of the impact of registration and screening on colorectal cancer incidence and mortality in familial adenomatous polyposis and Lynch syndrome. Br J Surg 100 (13): 1719-31, 2013.24227356
Koskenvuo L, Pitkäniemi J, Rantanen M, et al.: Impact of Screening on Survival in Familial Adenomatous Polyposis. J Clin Gastroenterol 50 (1): 40-4, 2016.26485107
Hakulinen T, Seppä K, Lambert PC: Choosing the relative survival method for cancer survival estimation. Eur J Cancer 47 (14): 2202-10, 2011.21549589
Petersen GM: Genetic testing and counseling in familial adenomatous polyposis. Oncology (Huntingt) 10 (1): 89-94; discussion 97-8, 1996.8924369 96401961
Church J, Burke C, McGannon E, et al.: Risk of rectal cancer in patients after colectomy and ileorectal anastomosis for familial adenomatous polyposis: a function of available surgical options. Dis Colon Rectum 46 (9): 1175-81, 2003.12972960 22852783
Guillem JG, Wood WC, Moley JF, et al.: ASCO/SSO review of current role of risk-reducing surgery in common hereditary cancer syndromes. Ann Surg Oncol 13 (10): 1296-321, 2006.16990987
Bertario L, Russo A, Radice P, et al.: Genotype and phenotype factors as determinants for rectal stump cancer in patients with familial adenomatous polyposis. Hereditary Colorectal Tumors Registry. Ann Surg 231 (4): 538-43, 2000.10749615 20213219
Heiskanen I, Järvinen HJ: Fate of the rectal stump after colectomy and ileorectal anastomosis for familial adenomatous polyposis. Int J Colorectal Dis 12 (1): 9-13, 1997.9112143 97266349
Bülow S, Bülow C, Vasen H, et al.: Colectomy and ileorectal anastomosis is still an option for selected patients with familial adenomatous polyposis. Dis Colon Rectum 51 (9): 1318-23, 2008.18523824
De Cosse JJ, Bülow S, Neale K, et al.: Rectal cancer risk in patients treated for familial adenomatous polyposis. The Leeds Castle Polyposis Group. Br J Surg 79 (12): 1372-5, 1992.1336702
Bess MA, Adson MA, Elveback LR, et al.: Rectal cancer following colectomy for polyposis. Arch Surg 115 (4): 460-7, 1980.7362454
Iwama T, Mishima Y: Factors affecting the risk of rectal cancer following rectum-preserving surgery in patients with familial adenomatous polyposis. Dis Colon Rectum 37 (10): 1024-6, 1994.7924709
Bülow S, Højen H, Buntzen S, et al.: Primary and secondary restorative proctocolectomy for familial adenomatous polyposis: complications and long-term bowel function. Colorectal Dis 15 (4): 436-41, 2013.22958269
Church J, Burke C, McGannon E, et al.: Predicting polyposis severity by proctoscopy: how reliable is it? Dis Colon Rectum 44 (9): 1249-54, 2001.11584194
Nieuwenhuis MH, Bülow S, Björk J, et al.: Genotype predicting phenotype in familial adenomatous polyposis: a practical application to the choice of surgery. Dis Colon Rectum 52 (7): 1259-63, 2009.19571702
Vasen HF, van der Luijt RB, Slors JF, et al.: Molecular genetic tests as a guide to surgical management of familial adenomatous polyposis. Lancet 348 (9025): 433-5, 1996.8709782
Wu JS, Paul P, McGannon EA, et al.: APC genotype, polyp number, and surgical options in familial adenomatous polyposis. Ann Surg 227 (1): 57-62, 1998.9445111
Nieuwenhuis MH, Mathus-Vliegen LM, Slors FJ, et al.: Genotype-phenotype correlations as a guide in the management of familial adenomatous polyposis. Clin Gastroenterol Hepatol 5 (3): 374-8, 2007.17368237
Lovegrove RE, Tilney HS, Heriot AG, et al.: A comparison of adverse events and functional outcomes after restorative proctocolectomy for familial adenomatous polyposis and ulcerative colitis. Dis Colon Rectum 49 (9): 1293-306, 2006.16830218
Parc YR, Olschwang S, Desaint B, et al.: Familial adenomatous polyposis: prevalence of adenomas in the ileal pouch after restorative proctocolectomy. Ann Surg 233 (3): 360-4, 2001.11224623
Groves CJ, Beveridge G, Swain DJ, et al.: Prevalence and morphology of pouch and ileal adenomas in familial adenomatous polyposis. Dis Colon Rectum 48 (4): 816-23, 2005.15747076
Lee CHA, Kalady MF, Burke CA, et al.: Incidence and Management of Rectal Cuff and Anal Transitional Zone Neoplasia in Patients With Familial Adenomatous Polyposis. Dis Colon Rectum 64 (8): 977-985, 2021.33960328
Ooi BS, Remzi FH, Gramlich T, et al.: Anal transitional zone cancer after restorative proctocolectomy and ileoanal anastomosis in familial adenomatous polyposis: report of two cases. Dis Colon Rectum 46 (10): 1418-23; discussion 1422-3, 2003.14530685
Steinbach G, Lynch PM, Phillips RK, et al.: The effect of celecoxib, a cyclooxygenase-2 inhibitor, in familial adenomatous polyposis. N Engl J Med 342 (26): 1946-52, 2000.10874062 20322282
Giardiello FM, Yang VW, Hylind LM, et al.: Primary chemoprevention of familial adenomatous polyposis with sulindac. N Engl J Med 346 (14): 1054-9, 2002.11932472 21930400
Lynch PM, Burke CA, Phillips R, et al.: An international randomised trial of celecoxib versus celecoxib plus difluoromethylornithine in patients with familial adenomatous polyposis. Gut 65 (2): 286-95, 2016.25792707
Burke CA, Dekker E, Lynch P, et al.: Eflornithine plus Sulindac for Prevention of Progression in Familial Adenomatous Polyposis. N Engl J Med 383 (11): 1028-1039, 2020.32905675
Balaguer F, Stoffel EM, Burke CA, et al.: Combination of Sulindac and Eflornithine Delays the Need for Lower Gastrointestinal Surgery in Patients With Familial Adenomatous Polyposis: Post Hoc Analysis of a Randomized Clinical Trial. Dis Colon Rectum 65 (4): 536-545, 2022.34261858
Lynch PM, Ayers GD, Hawk E, et al.: The safety and efficacy of celecoxib in children with familial adenomatous polyposis. Am J Gastroenterol 105 (6): 1437-43, 2010.20234350
West NJ, Clark SK, Phillips RK, et al.: Eicosapentaenoic acid reduces rectal polyp number and size in familial adenomatous polyposis. Gut 59 (7): 918-25, 2010.20348368
Phillips RK, Wallace MH, Lynch PM, et al.: A randomised, double blind, placebo controlled study of celecoxib, a selective cyclooxygenase 2 inhibitor, on duodenal polyposis in familial adenomatous polyposis. Gut 50 (6): 857-60, 2002.12010890 22006681
Nugent KP, Farmer KC, Spigelman AD, et al.: Randomized controlled trial of the effect of sulindac on duodenal and rectal polyposis and cell proliferation in patients with familial adenomatous polyposis. Br J Surg 80 (12): 1618-9, 1993.8298943 94130067
Jacoby RF, Cole CE, Hawk ET, et al.: Ursodeoxycholate/Sulindac combination treatment effectively prevents intestinal adenomas in a mouse model of polyposis. Gastroenterology 127 (3): 838-44, 2004.15362039
Parc Y, Desaint B, Fléjou JF, et al.: The effect of ursodesoxycholic acid on duodenal adenomas in familial adenomatous polyposis: a prospective randomized placebo-control trial. Colorectal Dis 14 (7): 854-60, 2012.21899713
van Heumen BW, Roelofs HM, Vink-Börger ME, et al.: Ursodeoxycholic acid counteracts celecoxib in reduction of duodenal polyps in patients with familial adenomatous polyposis: a multicentre, randomized controlled trial. Orphanet J Rare Dis 8: 118, 2013.23919274
Fitzgerald GA: Coxibs and cardiovascular disease. N Engl J Med 351 (17): 1709-11, 2004.15470192
Solomon SD, McMurray JJ, Pfeffer MA, et al.: Cardiovascular risk associated with celecoxib in a clinical trial for colorectal adenoma prevention. N Engl J Med 352 (11): 1071-80, 2005.15713944
Bresalier RS, Sandler RS, Quan H, et al.: Cardiovascular events associated with rofecoxib in a colorectal adenoma chemoprevention trial. N Engl J Med 352 (11): 1092-102, 2005.15713943
Giardiello FM, Hamilton SR, Krush AJ, et al.: Treatment of colonic and rectal adenomas with sulindac in familial adenomatous polyposis. N Engl J Med 328 (18): 1313-6, 1993.8385741 93226004
Roberts RB, Min L, Washington MK, et al.: Importance of epidermal growth factor receptor signaling in establishment of adenomas and maintenance of carcinomas during intestinal tumorigenesis. Proc Natl Acad Sci U S A 99 (3): 1521-6, 2002.11818567
Samadder NJ, Neklason DW, Boucher KM, et al.: Effect of Sulindac and Erlotinib vs Placebo on Duodenal Neoplasia in Familial Adenomatous Polyposis: A Randomized Clinical Trial. JAMA 315 (12): 1266-75, 2016 Mar 22-29.27002448
Samadder NJ, Kuwada SK, Boucher KM, et al.: Association of Sulindac and Erlotinib vs Placebo With Colorectal Neoplasia in Familial Adenomatous Polyposis: Secondary Analysis of a Randomized Clinical Trial. JAMA Oncol 4 (5): 671-677, 2018.29423501
Rinella ES, Threadgill DW: Efficacy of EGFR inhibition is modulated by model, sex, genetic background and diet: implications for preclinical cancer prevention and therapy trials. PLoS One 7 (6): e39552, 2012.22761823
Tonelli F, Ficari F, Valanzano R, et al.: Treatment of desmoids and mesenteric fibromatosis in familial adenomatous polyposis with raloxifene. Tumori 89 (4): 391-6, 2003 Jul-Aug.14606641
Hansmann A, Adolph C, Vogel T, et al.: High-dose tamoxifen and sulindac as first-line treatment for desmoid tumors. Cancer 100 (3): 612-20, 2004.14745880
Lindor NM, Dozois R, Nelson H, et al.: Desmoid tumors in familial adenomatous polyposis: a pilot project evaluating efficacy of treatment with pirfenidone. Am J Gastroenterol 98 (8): 1868-74, 2003.12907346
Mace J, Sybil Biermann J, Sondak V, et al.: Response of extraabdominal desmoid tumors to therapy with imatinib mesylate. Cancer 95 (11): 2373-9, 2002.12436445
Penel N, Le Cesne A, Bui BN, et al.: Imatinib for progressive and recurrent aggressive fibromatosis (desmoid tumors): an FNCLCC/French Sarcoma Group phase II trial with a long-term follow-up. Ann Oncol 22 (2): 452-7, 2011.20622000
Kasper B, Gruenwald V, Reichardt P, et al.: Imatinib induces sustained progression arrest in RECIST progressive desmoid tumours: Final results of a phase II study of the German Interdisciplinary Sarcoma Group (GISG). Eur J Cancer 76: 60-67, 2017.28282612
Gounder MM, Mahoney MR, Van Tine BA, et al.: Sorafenib for Advanced and Refractory Desmoid Tumors. N Engl J Med 379 (25): 2417-2428, 2018.30575484
Latchford AR, Sturt NJ, Neale K, et al.: A 10-year review of surgery for desmoid disease associated with familial adenomatous polyposis. Br J Surg 93 (10): 1258-64, 2006.16952208
Heiskanen I, Järvinen HJ: Occurrence of desmoid tumours in familial adenomatous polyposis and results of treatment. Int J Colorectal Dis 11 (4): 157-62, 1996.8876270
Wood LD, Salaria SN, Cruise MW, et al.: Upper GI tract lesions in familial adenomatous polyposis (FAP): enrichment of pyloric gland adenomas and other gastric and duodenal neoplasms. Am J Surg Pathol 38 (3): 389-93, 2014.24525509
Nakamura K, Nonaka S, Nakajima T, et al.: Clinical outcomes of gastric polyps and neoplasms in patients with familial adenomatous polyposis. Endosc Int Open 5 (3): E137-E145, 2017.28271094
Park JS, Choi GS, Kim HJ, et al.: Natural orifice specimen extraction versus conventional laparoscopically assisted right hemicolectomy. Br J Surg 98 (5): 710-5, 2011.21305535
Johnson MD, Mackey R, Brown N, et al.: Outcome based on management for duodenal adenomas: sporadic versus familial disease. J Gastrointest Surg 14 (2): 229-35, 2010.19937193
de Vos tot Nederveen Cappel WH, Järvinen HJ, Björk J, et al.: Worldwide survey among polyposis registries of surgical management of severe duodenal adenomatosis in familial adenomatous polyposis. Br J Surg 90 (6): 705-10, 2003.12808618
Balmaña J, Balaguer F, Cervantes A, et al.: Familial risk-colorectal cancer: ESMO Clinical Practice Guidelines. Ann Oncol 24 (Suppl 6): vi73-80, 2013.23813931
Bülow S, Christensen IJ, Højen H, et al.: Duodenal surveillance improves the prognosis after duodenal cancer in familial adenomatous polyposis. Colorectal Dis 14 (8): 947-52, 2012.21973191
Ahmad NA, Kochman ML, Long WB, et al.: Efficacy, safety, and clinical outcomes of endoscopic mucosal resection: a study of 101 cases. Gastrointest Endosc 55 (3): 390-6, 2002.11868015
Heiskanen I, Kellokumpu I, Järvinen H: Management of duodenal adenomas in 98 patients with familial adenomatous polyposis. Endoscopy 31 (6): 412-6, 1999.10494676 99422867
Penna C, Phillips RK, Tiret E, et al.: Surgical polypectomy of duodenal adenomas in familial adenomatous polyposis: experience of two European centres. Br J Surg 80 (8): 1027-9, 1993.8402056 94005573
Mackey R, Walsh RM, Chung R, et al.: Pancreas-sparing duodenectomy is effective management for familial adenomatous polyposis. J Gastrointest Surg 9 (8): 1088-93; discussion 1093, 2005.16269379
Collard MK, Lefevre JH, Ahmed O, et al.: Ten-year impact of pancreaticoduodenectomy on bowel function and quality of life of patients with ileal pouch-anal anastomosis for familial adenomatous polyposis. HPB (Oxford) 22 (10): 1402-1410, 2020.32019738
Lepistö A, Kiviluoto T, Halttunen J, et al.: Surveillance and treatment of duodenal adenomatosis in familial adenomatous polyposis. Endoscopy 41 (6): 504-9, 2009.19533554
Wallace MH, Phillips RK: Upper gastrointestinal disease in patients with familial adenomatous polyposis. Br J Surg 85 (6): 742-50, 1998.9667698
Parc Y, Mabrut JY, Shields C, et al.: Surgical management of the duodenal manifestations of familial adenomatous polyposis. Br J Surg 98 (4): 480-4, 2011.21656714
Penna C, Bataille N, Balladur P, et al.: Surgical treatment of severe duodenal polyposis in familial adenomatous polyposis. Br J Surg 85 (5): 665-8, 1998.9635818
Hirasawa R, Iishi H, Tatsuta M, et al.: Clinicopathologic features and endoscopic resection of duodenal adenocarcinomas and adenomas with the submucosal saline injection technique. Gastrointest Endosc 46 (6): 507-13, 1997.9434217
Catalano MF, Linder JD, Chak A, et al.: Endoscopic management of adenoma of the major duodenal papilla. Gastrointest Endosc 59 (2): 225-32, 2004.14745396
Alarcon FJ, Burke CA, Church JM, et al.: Familial adenomatous polyposis: efficacy of endoscopic and surgical treatment for advanced duodenal adenomas. Dis Colon Rectum 42 (12): 1533-6, 1999.10613470
Biasco G, Nobili E, Calabrese C, et al.: Impact of surgery on the development of duodenal cancer in patients with familial adenomatous polyposis. Dis Colon Rectum 49 (12): 1860-6, 2006.17103055
Chung RS, Church JM, vanStolk R: Pancreas-sparing duodenectomy: indications, surgical technique, and results. Surgery 117 (3): 254-9, 1995.7878529
Tsiotos GG, Sarr MG: Pancreas-preserving total duodenectomy. Dig Surg 15 (5): 398-403, 1998.9845621
Sarmiento JM, Thompson GB, Nagorney DM, et al.: Pancreas-sparing duodenectomy for duodenal polyposis. Arch Surg 137 (5): 557-62; discussion 562-3, 2002.11982469
Kalady MF, Clary BM, Tyler DS, et al.: Pancreas-preserving duodenectomy in the management of duodenal familial adenomatous polyposis. J Gastrointest Surg 6 (1): 82-7, 2002 Jan-Feb.11986022
Eisenberger CF, Knoefel WT, Peiper M, et al.: Pancreas-sparing duodenectomy in duodenal pathology: indications and results. Hepatogastroenterology 51 (57): 727-31, 2004 May-Jun.15143902
Jasperson KW, Tuohy TM, Neklason DW, et al.: Hereditary and familial colon cancer. Gastroenterology 138 (6): 2044-58, 2010.20420945
Jarrar AM, Milas M, Mitchell J, et al.: Screening for thyroid cancer in patients with familial adenomatous polyposis. Ann Surg 253 (3): 515-21, 2011.21173694
Aretz S, Koch A, Uhlhaas S, et al.: Should children at risk for familial adenomatous polyposis be screened for hepatoblastoma and children with apparently sporadic hepatoblastoma be screened for APC germline mutations? Pediatr Blood Cancer 47 (6): 811-8, 2006.16317745
Leppert M, Burt R, Hughes JP, et al.: Genetic analysis of an inherited predisposition to colon cancer in a family with a variable number of adenomatous polyps. N Engl J Med 322 (13): 904-8, 1990.2156161 90190770
Lynch HT, Smyrk TC: Classification of familial adenomatous polyposis: a diagnostic nightmare. Am J Hum Genet 62 (6): 1288-9, 1998.9585618 98254448
Giardiello FM, Brensinger JD, Luce MC, et al.: Phenotypic expression of disease in families that have mutations in the 5' region of the adenomatous polyposis coli gene. Ann Intern Med 126 (7): 514-9, 1997.9092316
White S, Bubb VJ, Wyllie AH: Germline APC mutation (Gln1317) in a cancer-prone family that does not result in familial adenomatous polyposis. Genes Chromosomes Cancer 15 (2): 122-8, 1996.8834176 96431094
Gonçalves V, Theisen P, Antunes O, et al.: A missense mutation in the APC tumor suppressor gene disrupts an ASF/SF2 splicing enhancer motif and causes pathogenic skipping of exon 14. Mutat Res 662 (1-2): 33-6, 2009.19111562
Heppner Goss K, Trzepacz C, Tuohy TM, et al.: Attenuated APC alleles produce functional protein from internal translation initiation. Proc Natl Acad Sci U S A 99 (12): 8161-6, 2002.12034871
Nieuwenhuis MH, Vasen HF: Correlations between mutation site in APC and phenotype of familial adenomatous polyposis (FAP): a review of the literature. Crit Rev Oncol Hematol 61 (2): 153-61, 2007.17064931
Scott RJ, Meldrum C, Crooks R, et al.: Familial adenomatous polyposis: more evidence for disease diversity and genetic heterogeneity. Gut 48 (4): 508-14, 2001.11247895
Knudsen AL, Bisgaard ML, Bülow S: Attenuated familial adenomatous polyposis (AFAP). A review of the literature. Fam Cancer 2 (1): 43-55, 2003.14574166
Vasen HF, Möslein G, Alonso A, et al.: Guidelines for the clinical management of familial adenomatous polyposis (FAP). Gut 57 (5): 704-13, 2008.18194984
Nielsen M, Morreau H, Vasen HF, et al.: MUTYH-associated polyposis (MAP). Crit Rev Oncol Hematol 79 (1): 1-16, 2011.20663686
Nielsen M, Joerink-van de Beld MC, Jones N, et al.: Analysis of MUTYH genotypes and colorectal phenotypes in patients With MUTYH-associated polyposis. Gastroenterology 136 (2): 471-6, 2009.19032956
Nielsen M, Franken PF, Reinards TH, et al.: Multiplicity in polyp count and extracolonic manifestations in 40 Dutch patients with MYH associated polyposis coli (MAP). J Med Genet 42 (9): e54, 2005.16140997
Knopperts AP, Nielsen M, Niessen RC, et al.: Contribution of bi-allelic germline MUTYH mutations to early-onset and familial colorectal cancer and to low number of adenomatous polyps: case-series and literature review. Fam Cancer 12 (1): 43-50, 2013.23007840
Sampson JR, Dolwani S, Jones S, et al.: Autosomal recessive colorectal adenomatous polyposis due to inherited mutations of MYH. Lancet 362 (9377): 39-41, 2003.12853198
Dolwani S, Williams GT, West KP, et al.: Analysis of inherited MYH/(MutYH) mutations in British Asian patients with colorectal cancer. Gut 56 (4): 593, 2007.17369389
Gismondi V, Meta M, Bonelli L, et al.: Prevalence of the Y165C, G382D and 1395delGGA germline mutations of the MYH gene in Italian patients with adenomatous polyposis coli and colorectal adenomas. Int J Cancer 109 (5): 680-4, 2004.14999774
Ricci MT, Miccoli S, Turchetti D, et al.: Type and frequency of MUTYH variants in Italian patients with suspected MAP: a retrospective multicenter study. J Hum Genet 62 (2): 309-315, 2017.27829682
Isidro G, Laranjeira F, Pires A, et al.: Germline MUTYH (MYH) mutations in Portuguese individuals with multiple colorectal adenomas. Hum Mutat 24 (4): 353-4, 2004.15366000
Kim DW, Kim IJ, Kang HC, et al.: Germline mutations of the MYH gene in Korean patients with multiple colorectal adenomas. Int J Colorectal Dis 22 (10): 1173-8, 2007.17703316
Yanaru-Fujisawa R, Matsumoto T, Ushijima Y, et al.: Genomic and functional analyses of MUTYH in Japanese patients with adenomatous polyposis. Clin Genet 73 (6): 545-53, 2008.18422726
Kim JC, Ka IH, Lee YM, et al.: MYH, OGG1, MTH1, and APC alterations involved in the colorectal tumorigenesis of Korean patients with multiple adenomas. Virchows Arch 450 (3): 311-9, 2007.17252231
Hampel H: Genetic testing for hereditary colorectal cancer. Surg Oncol Clin N Am 18 (4): 687-703, 2009.19793575
Jones N, Vogt S, Nielsen M, et al.: Increased colorectal cancer incidence in obligate carriers of heterozygous mutations in MUTYH. Gastroenterology 137 (2): 489-94, 494.e1; quiz 725-6, 2009.19394335
Sieber OM, Lipton L, Crabtree M, et al.: Multiple colorectal adenomas, classic adenomatous polyposis, and germ-line mutations in MYH. N Engl J Med 348 (9): 791-9, 2003.12606733 22495241
Nieuwenhuis MH, Vogt S, Jones N, et al.: Evidence for accelerated colorectal adenoma--carcinoma progression in MUTYH-associated polyposis? Gut 61 (5): 734-8, 2012.21846783
Win AK, Dowty JG, Cleary SP, et al.: Risk of colorectal cancer for carriers of mutations in MUTYH, with and without a family history of cancer. Gastroenterology 146 (5): 1208-11.e1-5, 2014.24444654
Morak M, Laner A, Bacher U, et al.: MUTYH-associated polyposis - variability of the clinical phenotype in patients with biallelic and monoallelic MUTYH mutations and report on novel mutations. Clin Genet 78 (4): 353-63, 2010.20618354
Boparai KS, Dekker E, Van Eeden S, et al.: Hyperplastic polyps and sessile serrated adenomas as a phenotypic expression of MYH-associated polyposis. Gastroenterology 135 (6): 2014-8, 2008.19013464
Nascimbeni R, Pucciarelli S, Di Lorenzo D, et al.: Rectum-sparing surgery may be appropriate for biallelic MutYH-associated polyposis. Dis Colon Rectum 53 (12): 1670-5, 2010.21178863
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Colorectal Cancer Screening. Version 1.2024. Plymouth Meeting, PA: National Comprehensive Cancer Network, 2024. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/colorectal_screening.pdf) Last accessed March 3, 2024.
Win AK, Cleary SP, Dowty JG, et al.: Cancer risks for monoallelic MUTYH mutation carriers with a family history of colorectal cancer. Int J Cancer 129 (9): 2256-62, 2011.21171015
Vogt S, Jones N, Christian D, et al.: Expanded extracolonic tumor spectrum in MUTYH-associated polyposis. Gastroenterology 137 (6): 1976-85.e1-10, 2009.19732775
Lefevre JH, Rodrigue CM, Mourra N, et al.: Implication of MYH in colorectal polyposis. Ann Surg 244 (6): 874-9; discussion 879-80, 2006.17122612
Wasielewski M, Out AA, Vermeulen J, et al.: Increased MUTYH mutation frequency among Dutch families with breast cancer and colorectal cancer. Breast Cancer Res Treat 124 (3): 635-41, 2010.20191381
Poulsen ML, Bisgaard ML: MUTYH Associated Polyposis (MAP). Curr Genomics 9 (6): 420-35, 2008.19506731
Goodenberger M, Lindor NM: Lynch syndrome and MYH-associated polyposis: review and testing strategy. J Clin Gastroenterol 45 (6): 488-500, 2011.21325953
Walton SJ, Kallenberg FG, Clark SK, et al.: Frequency and Features of Duodenal Adenomas in Patients With MUTYH-Associated Polyposis. Clin Gastroenterol Hepatol 14 (7): 986-92, 2016.26905905
Win AK, Hopper JL, Jenkins MA: Association between monoallelic MUTYH mutation and colorectal cancer risk: a meta-regression analysis. Fam Cancer 10 (1): 1-9, 2011.21061173
Giráldez MD, Balaguer F, Caldés T, et al.: Association of MUTYH and MSH6 germline mutations in colorectal cancer patients. Fam Cancer 8 (4): 525-31, 2009.19685280
Steinke V, Rahner N, Morak M, et al.: No association between MUTYH and MSH6 germline mutations in 64 HNPCC patients. Eur J Hum Genet 16 (5): 587-92, 2008.18301448
Win AK, Reece JC, Buchanan DD, et al.: Risk of colorectal cancer for people with a mutation in both a MUTYH and a DNA mismatch repair gene. Fam Cancer 14 (4): 575-83, 2015.26202870
Boland CR, Troncale FJ: Familial colonic cancer without antecedent polyposis. Ann Intern Med 100 (5): 700-1, 1984.6712034
Vasen HF, Mecklin JP, Khan PM, et al.: The International Collaborative Group on Hereditary Non-Polyposis Colorectal Cancer (ICG-HNPCC). Dis Colon Rectum 34 (5): 424-5, 1991.2022152 91215971
Bodmer WF, Bailey CJ, Bodmer J, et al.: Localization of the gene for familial adenomatous polyposis on chromosome 5. Nature 328 (6131): 614-6, 1987 Aug 13-19.3039373
Groden J, Thliveris A, Samowitz W, et al.: Identification and characterization of the familial adenomatous polyposis coli gene. Cell 66 (3): 589-600, 1991.1651174 91330306
Vasen HF, Watson P, Mecklin JP, et al.: New clinical criteria for hereditary nonpolyposis colorectal cancer (HNPCC, Lynch syndrome) proposed by the International Collaborative group on HNPCC. Gastroenterology 116 (6): 1453-6, 1999.10348829 99278259
Lindor NM, Rabe K, Petersen GM, et al.: Lower cancer incidence in Amsterdam-I criteria families without mismatch repair deficiency: familial colorectal cancer type X. JAMA 293 (16): 1979-85, 2005.15855431
Rodriguez-Bigas MA, Boland CR, Hamilton SR, et al.: A National Cancer Institute Workshop on Hereditary Nonpolyposis Colorectal Cancer Syndrome: meeting highlights and Bethesda guidelines. J Natl Cancer Inst 89 (23): 1758-62, 1997.9392616 98052509
Umar A, Boland CR, Terdiman JP, et al.: Revised Bethesda Guidelines for hereditary nonpolyposis colorectal cancer (Lynch syndrome) and microsatellite instability. J Natl Cancer Inst 96 (4): 261-8, 2004.14970275
Laghi L, Bianchi P, Roncalli M, et al.: Re: Revised Bethesda guidelines for hereditary nonpolyposis colorectal cancer (Lynch syndrome) and microsatellite instability. J Natl Cancer Inst 96 (18): 1402-3; author reply 1403-4, 2004.15367575
Hampel H, Frankel WL, Martin E, et al.: Feasibility of screening for Lynch syndrome among patients with colorectal cancer. J Clin Oncol 26 (35): 5783-8, 2008.18809606
Grover S, Stoffel EM, Bussone L, et al.: Physician assessment of family cancer history and referral for genetic evaluation in colorectal cancer patients. Clin Gastroenterol Hepatol 2 (9): 813-9, 2004.15354282
Barnetson RA, Tenesa A, Farrington SM, et al.: Identification and survival of carriers of mutations in DNA mismatch-repair genes in colon cancer. N Engl J Med 354 (26): 2751-63, 2006.16807412
Kastrinos F, Steyerberg EW, Mercado R, et al.: The PREMM(1,2,6) model predicts risk of MLH1, MSH2, and MSH6 germline mutations based on cancer history. Gastroenterology 140 (1): 73-81, 2011.20727894
Chen S, Wang W, Lee S, et al.: Prediction of germline mutations and cancer risk in the Lynch syndrome. JAMA 296 (12): 1479-87, 2006.17003396
Kastrinos F, Uno H, Ukaegbu C, et al.: Development and Validation of the PREMM5 Model for Comprehensive Risk Assessment of Lynch Syndrome. J Clin Oncol 35 (19): 2165-2172, 2017.28489507
Yurgelun MB, Uno H, Furniss CS, et al.: Development and Validation of the PREMMplus Model for Multigene Hereditary Cancer Risk Assessment. J Clin Oncol 40 (35): 4083-4094, 2022.35960913
Kastrinos F, Allen JI, Stockwell DH, et al.: Development and validation of a colon cancer risk assessment tool for patients undergoing colonoscopy. Am J Gastroenterol 104 (6): 1508-18, 2009.19491864
Balaguer F, Balmaña J, Castellví-Bel S, et al.: Validation and extension of the PREMM1,2 model in a population-based cohort of colorectal cancer patients. Gastroenterology 134 (1): 39-46, 2008.18061181
Balmaña J, Balaguer F, Castellví-Bel S, et al.: Comparison of predictive models, clinical criteria and molecular tumour screening for the identification of patients with Lynch syndrome in a population-based cohort of colorectal cancer patients. J Med Genet 45 (9): 557-63, 2008.18603628
Green RC, Parfrey PS, Woods MO, et al.: Prediction of Lynch syndrome in consecutive patients with colorectal cancer. J Natl Cancer Inst 101 (5): 331-40, 2009.19244167
Kastrinos F, Steyerberg EW, Balmaña J, et al.: Comparison of the clinical prediction model PREMM(1,2,6) and molecular testing for the systematic identification of Lynch syndrome in colorectal cancer. Gut 62 (2): 272-9, 2013.22345660
Khan O, Blanco A, Conrad P, et al.: Performance of Lynch syndrome predictive models in a multi-center US referral population. Am J Gastroenterol 106 (10): 1822-7; quiz 1828, 2011.21747416
Pouchet CJ, Wong N, Chong G, et al.: A comparison of models used to predict MLH1, MSH2 and MSH6 mutation carriers. Ann Oncol 20 (4): 681-8, 2009.19164453
Monzon JG, Cremin C, Armstrong L, et al.: Validation of predictive models for germline mutations in DNA mismatch repair genes in colorectal cancer. Int J Cancer 126 (4): 930-9, 2010.19653273
Kastrinos F, Balmaña J, Syngal S: Prediction models in Lynch syndrome. Fam Cancer 12 (2): 217-28, 2013.23553450
Balmaña J, Stockwell DH, Steyerberg EW, et al.: Prediction of MLH1 and MSH2 mutations in Lynch syndrome. JAMA 296 (12): 1469-78, 2006.17003395
Luba DG, DiSario JA, Rock C, et al.: Community Practice Implementation of a Self-administered Version of PREMM1,2,6 to Assess Risk for Lynch Syndrome. Clin Gastroenterol Hepatol 16 (1): 49-58, 2018.28668538
Kastrinos F, Ojha RP, Leenen C, et al.: Comparison of Prediction Models for Lynch Syndrome Among Individuals With Colorectal Cancer. J Natl Cancer Inst 108 (2): , 2016.26582061
Weber JL, May PE: Abundant class of human DNA polymorphisms which can be typed using the polymerase chain reaction. Am J Hum Genet 44 (3): 388-96, 1989.2916582 89132589
Vilar E, Gruber SB: Microsatellite instability in colorectal cancer-the stable evidence. Nat Rev Clin Oncol 7 (3): 153-62, 2010.20142816
Haraldsdottir S, Roth R, Pearlman R, et al.: Mismatch repair deficiency concordance between primary colorectal cancer and corresponding metastasis. Fam Cancer 15 (2): 253-60, 2016.26666765
Grady WM, Carethers JM: Genomic and epigenetic instability in colorectal cancer pathogenesis. Gastroenterology 135 (4): 1079-99, 2008.18773902
Greenson JK, Huang SC, Herron C, et al.: Pathologic predictors of microsatellite instability in colorectal cancer. Am J Surg Pathol 33 (1): 126-33, 2009.18830122
Boland CR, Thibodeau SN, Hamilton SR, et al.: A National Cancer Institute Workshop on Microsatellite Instability for cancer detection and familial predisposition: development of international criteria for the determination of microsatellite instability in colorectal cancer. Cancer Res 58 (22): 5248-57, 1998.9823339 99040673
Thibodeau SN, French AJ, Roche PC, et al.: Altered expression of hMSH2 and hMLH1 in tumors with microsatellite instability and genetic alterations in mismatch repair genes. Cancer Res 56 (21): 4836-40, 1996.8895729 97050990
Cawkwell L, Gray S, Murgatroyd H, et al.: Choice of management strategy for colorectal cancer based on a diagnostic immunohistochemical test for defective mismatch repair. Gut 45 (3): 409-15, 1999.10446111 99376907
Lindor NM, Burgart LJ, Leontovich O, et al.: Immunohistochemistry versus microsatellite instability testing in phenotyping colorectal tumors. J Clin Oncol 20 (4): 1043-8, 2002.11844828 21833574
de La Chapelle A: Microsatellite instability phenotype of tumors: genotyping or immunohistochemistry? The jury is still out. J Clin Oncol 20 (4): 897-9, 2002.11844809 21833555
Peltomäki P: Update on Lynch syndrome genomics. Fam Cancer 15 (3): 385-93, 2016.26873718
Rumilla K, Schowalter KV, Lindor NM, et al.: Frequency of deletions of EPCAM (TACSTD1) in MSH2-associated Lynch syndrome cases. J Mol Diagn 13 (1): 93-9, 2011.21227399
Kovacs ME, Papp J, Szentirmay Z, et al.: Deletions removing the last exon of TACSTD1 constitute a distinct class of mutations predisposing to Lynch syndrome. Hum Mutat 30 (2): 197-203, 2009.19177550
Rosty C, Clendenning M, Walsh MD, et al.: Germline mutations in PMS2 and MLH1 in individuals with solitary loss of PMS2 expression in colorectal carcinomas from the Colon Cancer Family Registry Cohort. BMJ Open 6 (2): e010293, 2016.26895986
Lynch HT, Boland CR, Rodriguez-Bigas MA, et al.: Who should be sent for genetic testing in hereditary colorectal cancer syndromes? J Clin Oncol 25 (23): 3534-42, 2007.17687158
Cunningham JM, Kim CY, Christensen ER, et al.: The frequency of hereditary defective mismatch repair in a prospective series of unselected colorectal carcinomas. Am J Hum Genet 69 (4): 780-90, 2001.11524701 21426337
Esteller M: Epigenetics in cancer. N Engl J Med 358 (11): 1148-59, 2008.18337604
Wang L, Cunningham JM, Winters JL, et al.: BRAF mutations in colon cancer are not likely attributable to defective DNA mismatch repair. Cancer Res 63 (17): 5209-12, 2003.14500346
Domingo E, Espín E, Armengol M, et al.: Activated BRAF targets proximal colon tumors with mismatch repair deficiency and MLH1 inactivation. Genes Chromosomes Cancer 39 (2): 138-42, 2004.14695993
Deng G, Bell I, Crawley S, et al.: BRAF mutation is frequently present in sporadic colorectal cancer with methylated hMLH1, but not in hereditary nonpolyposis colorectal cancer. Clin Cancer Res 10 (1 Pt 1): 191-5, 2004.14734469
Domingo E, Niessen RC, Oliveira C, et al.: BRAF-V600E is not involved in the colorectal tumorigenesis of HNPCC in patients with functional MLH1 and MSH2 genes. Oncogene 24 (24): 3995-8, 2005.15782118
Haraldsdottir S, Hampel H, Tomsic J, et al.: Colon and endometrial cancers with mismatch repair deficiency can arise from somatic, rather than germline, mutations. Gastroenterology 147 (6): 1308-1316.e1, 2014.25194673
Pearlman R, Frankel WL, Swanson BJ, et al.: Prospective Statewide Study of Universal Screening for Hereditary Colorectal Cancer: The Ohio Colorectal Cancer Prevention Initiative. JCO Precis Oncol 5: , 2021.34250417
Hampel H, Pearlman R, de la Chapelle A, et al.: Double somatic mismatch repair gene pathogenic variants as common as Lynch syndrome among endometrial cancer patients. Gynecol Oncol 160 (1): 161-168, 2021.33393477
Dixon K, Asrat MJ, Bedard AC, et al.: Integrating Tumor Sequencing Into Clinical Practice for Patients With Mismatch Repair-Deficient Lynch Syndrome Spectrum Cancers. Clin Transl Gastroenterol 12 (8): e00397, 2021.34397043
Antelo M, Golubicki M, Roca E, et al.: Lynch-like syndrome is as frequent as Lynch syndrome in early-onset nonfamilial nonpolyposis colorectal cancer. Int J Cancer 145 (3): 705-713, 2019.30693488
Carethers JM, Stoffel EM: Lynch syndrome and Lynch syndrome mimics: The growing complex landscape of hereditary colon cancer. World J Gastroenterol 21 (31): 9253-61, 2015.26309352
Bittles AH, Black ML: Evolution in health and medicine Sackler colloquium: Consanguinity, human evolution, and complex diseases. Proc Natl Acad Sci U S A 107 (Suppl 1): 1779-86, 2010.19805052
Hitchins MP: The role of epigenetics in Lynch syndrome. Fam Cancer 12 (2): 189-205, 2013.23462881
Gazzoli I, Loda M, Garber J, et al.: A hereditary nonpolyposis colorectal carcinoma case associated with hypermethylation of the MLH1 gene in normal tissue and loss of heterozygosity of the unmethylated allele in the resulting microsatellite instability-high tumor. Cancer Res 62 (14): 3925-8, 2002.12124320 22119414
Gylling A, Ridanpää M, Vierimaa O, et al.: Large genomic rearrangements and germline epimutations in Lynch syndrome. Int J Cancer 124 (10): 2333-40, 2009.19173287
Hitchins MP, Rapkins RW, Kwok CT, et al.: Dominantly inherited constitutional epigenetic silencing of MLH1 in a cancer-affected family is linked to a single nucleotide variant within the 5'UTR. Cancer Cell 20 (2): 200-13, 2011.21840485
Goel A, Nguyen TP, Leung HC, et al.: De novo constitutional MLH1 epimutations confer early-onset colorectal cancer in two new sporadic Lynch syndrome cases, with derivation of the epimutation on the paternal allele in one. Int J Cancer 128 (4): 869-78, 2011.20473912
Hitchins MP, Wong JJ, Suthers G, et al.: Inheritance of a cancer-associated MLH1 germ-line epimutation. N Engl J Med 356 (7): 697-705, 2007.17301300
Hampel H, Frankel WL, Martin E, et al.: Screening for the Lynch syndrome (hereditary nonpolyposis colorectal cancer). N Engl J Med 352 (18): 1851-60, 2005.15872200
Ladabaum U, Wang G, Terdiman J, et al.: Strategies to identify the Lynch syndrome among patients with colorectal cancer: a cost-effectiveness analysis. Ann Intern Med 155 (2): 69-79, 2011.21768580
Piñol V, Castells A, Andreu M, et al.: Accuracy of revised Bethesda guidelines, microsatellite instability, and immunohistochemistry for the identification of patients with hereditary nonpolyposis colorectal cancer. JAMA 293 (16): 1986-94, 2005.15855432
Baudhuin LM, Burgart LJ, Leontovich O, et al.: Use of microsatellite instability and immunohistochemistry testing for the identification of individuals at risk for Lynch syndrome. Fam Cancer 4 (3): 255-65, 2005.16136387
Lagerstedt Robinson K, Liu T, Vandrovcova J, et al.: Lynch syndrome (hereditary nonpolyposis colorectal cancer) diagnostics. J Natl Cancer Inst 99 (4): 291-9, 2007.17312306
Schofield L, Watson N, Grieu F, et al.: Population-based detection of Lynch syndrome in young colorectal cancer patients using microsatellite instability as the initial test. Int J Cancer 124 (5): 1097-102, 2009.19072991
Mills AM, Liou S, Ford JM, et al.: Lynch syndrome screening should be considered for all patients with newly diagnosed endometrial cancer. Am J Surg Pathol 38 (11): 1501-9, 2014.25229768
Giardiello FM, Allen JI, Axilbund JE, et al.: Guidelines on genetic evaluation and management of Lynch syndrome: a consensus statement by the US Multi-society Task Force on colorectal cancer. Am J Gastroenterol 109 (8): 1159-79, 2014.25070057
Rubenstein JH, Enns R, Heidelbaugh J, et al.: American Gastroenterological Association Institute Guideline on the Diagnosis and Management of Lynch Syndrome. Gastroenterology 149 (3): 777-82; quiz e16-7, 2015.26226577
Committee on Practice Bulletins-Gynecology, Society of Gynecologic Oncology: ACOG Practice Bulletin No. 147: Lynch syndrome. Obstet Gynecol 124 (5): 1042-54, 2014.25437740
Evaluation of Genomic Applications in Practice and Prevention (EGAPP) Working Group: Recommendations from the EGAPP Working Group: genetic testing strategies in newly diagnosed individuals with colorectal cancer aimed at reducing morbidity and mortality from Lynch syndrome in relatives. Genet Med 11 (1): 35-41, 2009.19125126
Palomaki GE, McClain MR, Melillo S, et al.: EGAPP supplementary evidence review: DNA testing strategies aimed at reducing morbidity and mortality from Lynch syndrome. Genet Med 11 (1): 42-65, 2009.19125127
Moreira L, Balaguer F, Lindor N, et al.: Identification of Lynch syndrome among patients with colorectal cancer. JAMA 308 (15): 1555-65, 2012.23073952
Boland CR, Shike M: Report from the Jerusalem workshop on Lynch syndrome-hereditary nonpolyposis colorectal cancer. Gastroenterology 138 (7): 2197.e1-7, 2010.20416305
Crucianelli F, Tricarico R, Turchetti D, et al.: MLH1 constitutional and somatic methylation in patients with MLH1 negative tumors fulfilling the revised Bethesda criteria. Epigenetics 9 (10): 1431-8, 2014.25437057
Leenen CH, Goverde A, de Bekker-Grob EW, et al.: Cost-effectiveness of routine screening for Lynch syndrome in colorectal cancer patients up to 70 years of age. Genet Med 18 (10): 966-73, 2016.26938782
Hampel H, Pearlman R, Beightol M, et al.: Assessment of Tumor Sequencing as a Replacement for Lynch Syndrome Screening and Current Molecular Tests for Patients With Colorectal Cancer. JAMA Oncol 4 (6): 806-813, 2018.29596542
Li D, Hoodfar E, Jiang SF, et al.: Comparison of Universal Versus Age-Restricted Screening of Colorectal Tumors for Lynch Syndrome Using Mismatch Repair Immunohistochemistry: A Cohort Study. Ann Intern Med 171 (1): 19-26, 2019.31181578
Barzi A, Sadeghi S, Kattan MW, et al.: Comparative effectiveness of screening strategies for Lynch syndrome. J Natl Cancer Inst 107 (4): , 2015.25794514
Stoffel EM, Mangu PB, Gruber SB, et al.: Hereditary colorectal cancer syndromes: American Society of Clinical Oncology Clinical Practice Guideline endorsement of the familial risk-colorectal cancer: European Society for Medical Oncology Clinical Practice Guidelines. J Clin Oncol 33 (2): 209-17, 2015.25452455
Goverde A, Spaander MC, van Doorn HC, et al.: Cost-effectiveness of routine screening for Lynch syndrome in endometrial cancer patients up to 70years of age. Gynecol Oncol 143 (3): 453-459, 2016.27789085
Cohen SA: Current Lynch syndrome tumor screening practices: a survey of genetic counselors. J Genet Couns 23 (1): 38-47, 2014.23674164
Beamer LC, Grant ML, Espenschied CR, et al.: Reflex immunohistochemistry and microsatellite instability testing of colorectal tumors for Lynch syndrome among US cancer programs and follow-up of abnormal results. J Clin Oncol 30 (10): 1058-63, 2012.22355048
Dineen S, Lynch PM, Rodriguez-Bigas MA, et al.: A Prospective Six Sigma Quality Improvement Trial to Optimize Universal Screening for Genetic Syndrome Among Patients With Young-Onset Colorectal Cancer. J Natl Compr Canc Netw 13 (7): 865-72, 2015.26150580
Heald B, Plesec T, Liu X, et al.: Implementation of universal microsatellite instability and immunohistochemistry screening for diagnosing lynch syndrome in a large academic medical center. J Clin Oncol 31 (10): 1336-40, 2013.23401454
Cragun D, DeBate RD, Vadaparampil ST, et al.: Comparing universal Lynch syndrome tumor-screening programs to evaluate associations between implementation strategies and patient follow-through. Genet Med 16 (10): 773-82, 2014.24651603
Ward RL, Hicks S, Hawkins NJ: Population-based molecular screening for Lynch syndrome: implications for personalized medicine. J Clin Oncol 31 (20): 2554-62, 2013.23733757
Hampel H, Frankel W, Panescu J, et al.: Screening for Lynch syndrome (hereditary nonpolyposis colorectal cancer) among endometrial cancer patients. Cancer Res 66 (15): 7810-7, 2006.16885385
Hampel H, Panescu J, Lockman J, et al.: Comment on: Screening for Lynch Syndrome (Hereditary Nonpolyposis Colorectal Cancer) among Endometrial Cancer Patients. Cancer Res 67 (19): 9603, 2007.17909073
Watkins JC, Yang EJ, Muto MG, et al.: Universal Screening for Mismatch-Repair Deficiency in Endometrial Cancers to Identify Patients With Lynch Syndrome and Lynch-like Syndrome. Int J Gynecol Pathol 36 (2): 115-127, 2017.27556954
Adar T, Rodgers LH, Shannon KM, et al.: Universal screening of both endometrial and colon cancers increases the detection of Lynch syndrome. Cancer 124 (15): 3145-3153, 2018.29750335
Kwon JS, Scott JL, Gilks CB, et al.: Testing women with endometrial cancer to detect Lynch syndrome. J Clin Oncol 29 (16): 2247-52, 2011.21537049
Latham A, Srinivasan P, Kemel Y, et al.: Microsatellite Instability Is Associated With the Presence of Lynch Syndrome Pan-Cancer. J Clin Oncol 37 (4): 286-295, 2019.30376427
Middha S, Zhang L, Nafa K, et al.: Reliable Pan-Cancer Microsatellite Instability Assessment by Using Targeted Next-Generation Sequencing Data. JCO Precis Oncol 2017: , 2017.30211344
Latham A, Shia J, Patel Z, et al.: Characterization and Clinical Outcomes of DNA Mismatch Repair-deficient Small Bowel Adenocarcinoma. Clin Cancer Res 27 (5): 1429-1437, 2021.33199489
Pearlman R, Frankel WL, Swanson B, et al.: Prevalence and Spectrum of Germline Cancer Susceptibility Gene Mutations Among Patients With Early-Onset Colorectal Cancer. JAMA Oncol 3 (4): 464-471, 2017.27978560
Yurgelun MB, Allen B, Kaldate RR, et al.: Identification of a Variety of Mutations in Cancer Predisposition Genes in Patients With Suspected Lynch Syndrome. Gastroenterology 149 (3): 604-13.e20, 2015.25980754
You YN, Borras E, Chang K, et al.: Detection of Pathogenic Germline Variants Among Patients With Advanced Colorectal Cancer Undergoing Tumor Genomic Profiling for Precision Medicine. Dis Colon Rectum 62 (4): 429-437, 2019.30730459
Yurgelun MB, Kulke MH, Fuchs CS, et al.: Cancer Susceptibility Gene Mutations in Individuals With Colorectal Cancer. J Clin Oncol 35 (10): 1086-1095, 2017.28135145
Espenschied CR, LaDuca H, Li S, et al.: Multigene Panel Testing Provides a New Perspective on Lynch Syndrome. J Clin Oncol 35 (22): 2568-2575, 2017.28514183
Roberts ME, Jackson SA, Susswein LR, et al.: MSH6 and PMS2 germ-line pathogenic variants implicated in Lynch syndrome are associated with breast cancer. Genet Med 20 (10): 1167-1174, 2018.29345684
Neumann PJ, Cohen JT, Weinstein MC: Updating cost-effectiveness--the curious resilience of the $50,000-per-QALY threshold. N Engl J Med 371 (9): 796-7, 2014.25162885
Gallego CJ, Shirts BH, Bennette CS, et al.: Next-Generation Sequencing Panels for the Diagnosis of Colorectal Cancer and Polyposis Syndromes: A Cost-Effectiveness Analysis. J Clin Oncol 33 (18): 2084-91, 2015.25940718
Bronner CE, Baker SM, Morrison PT, et al.: Mutation in the DNA mismatch repair gene homologue hMLH1 is associated with hereditary non-polyposis colon cancer. Nature 368 (6468): 258-61, 1994.8145827
Papadopoulos N, Nicolaides NC, Wei YF, et al.: Mutation of a mutL homolog in hereditary colon cancer. Science 263 (5153): 1625-9, 1994.8128251 94174309
Fishel R, Lescoe MK, Rao MR, et al.: The human mutator gene homolog MSH2 and its association with hereditary nonpolyposis colon cancer. Cell 75 (5): 1027-38, 1993.8252616
Leach FS, Nicolaides NC, Papadopoulos N, et al.: Mutations of a mutS homolog in hereditary nonpolyposis colorectal cancer. Cell 75 (6): 1215-25, 1993.8261515 94084796
Miyaki M, Konishi M, Tanaka K, et al.: Germline mutation of MSH6 as the cause of hereditary nonpolyposis colorectal cancer. Nat Genet 17 (3): 271-2, 1997.9354786 98016406
Nicolaides NC, Papadopoulos N, Liu B, et al.: Mutations of two PMS homologues in hereditary nonpolyposis colon cancer. Nature 371 (6492): 75-80, 1994.8072530 94352394
Worthley DL, Walsh MD, Barker M, et al.: Familial mutations in PMS2 can cause autosomal dominant hereditary nonpolyposis colorectal cancer. Gastroenterology 128 (5): 1431-6, 2005.15887124
Peltomäki P, Aaltonen LA, Sistonen P, et al.: Genetic mapping of a locus predisposing to human colorectal cancer. Science 260 (5109): 810-2, 1993.8484120
Lindblom A, Tannergård P, Werelius B, et al.: Genetic mapping of a second locus predisposing to hereditary non-polyposis colon cancer. Nat Genet 5 (3): 279-82, 1993.7903889
Ligtenberg MJ, Kuiper RP, Chan TL, et al.: Heritable somatic methylation and inactivation of MSH2 in families with Lynch syndrome due to deletion of the 3' exons of TACSTD1. Nat Genet 41 (1): 112-7, 2009.19098912
Kuiper RP, Vissers LE, Venkatachalam R, et al.: Recurrence and variability of germline EPCAM deletions in Lynch syndrome. Hum Mutat 32 (4): 407-14, 2011.21309036
Vasen HF: Clinical description of the Lynch syndrome [hereditary nonpolyposis colorectal cancer (HNPCC)]. Fam Cancer 4 (3): 219-25, 2005.16136381
National Cancer Institute: SEER Stat Fact Sheets: Colorectal Cancer. Bethesda, Md: National Institutes of Health. Available online (https://seer.cancer.gov/statfacts/html/colorect.html). Last accessed April 10, 2024.
Hampel H, Stephens JA, Pukkala E, et al.: Cancer risk in hereditary nonpolyposis colorectal cancer syndrome: later age of onset. Gastroenterology 129 (2): 415-21, 2005.16083698
Win AK, Jenkins MA, Dowty JG, et al.: Prevalence and Penetrance of Major Genes and Polygenes for Colorectal Cancer. Cancer Epidemiol Biomarkers Prev 26 (3): 404-412, 2017.27799157
Marra G, Boland CR: Hereditary nonpolyposis colorectal cancer: the syndrome, the genes, and historical perspectives. J Natl Cancer Inst 87 (15): 1114-25, 1995.7674315 95404628
Peltomäki P, Vasen HF: Mutations predisposing to hereditary nonpolyposis colorectal cancer: database and results of a collaborative study. The International Collaborative Group on Hereditary Nonpolyposis Colorectal Cancer. Gastroenterology 113 (4): 1146-58, 1997.9322509 97463808
Plazzer JP, Sijmons RH, Woods MO, et al.: The InSiGHT database: utilizing 100 years of insights into Lynch syndrome. Fam Cancer 12 (2): 175-80, 2013.23443670
Peltomäki P: Role of DNA mismatch repair defects in the pathogenesis of human cancer. J Clin Oncol 21 (6): 1174-9, 2003.12637487
Vasen HF, Stormorken A, Menko FH, et al.: MSH2 mutation carriers are at higher risk of cancer than MLH1 mutation carriers: a study of hereditary nonpolyposis colorectal cancer families. J Clin Oncol 19 (20): 4074-80, 2001.11600610
Ryan NAJ, Morris J, Green K, et al.: Association of Mismatch Repair Mutation With Age at Cancer Onset in Lynch Syndrome: Implications for Stratified Surveillance Strategies. JAMA Oncol 3 (12): 1702-1706, 2017.28772289
Quehenberger F, Vasen HF, van Houwelingen HC: Risk of colorectal and endometrial cancer for carriers of mutations of the hMLH1 and hMSH2 gene: correction for ascertainment. J Med Genet 42 (6): 491-6, 2005.15937084
Lin KM, Shashidharan M, Thorson AG, et al.: Cumulative incidence of colorectal and extracolonic cancers in MLH1 and MSH2 mutation carriers of hereditary nonpolyposis colorectal cancer. J Gastrointest Surg 2 (1): 67-71, 1998 Jan-Feb.9841970
Plaschke J, Engel C, Krüger S, et al.: Lower incidence of colorectal cancer and later age of disease onset in 27 families with pathogenic MSH6 germline mutations compared with families with MLH1 or MSH2 mutations: the German Hereditary Nonpolyposis Colorectal Cancer Consortium. J Clin Oncol 22 (22): 4486-94, 2004.15483016
Berends MJ, Wu Y, Sijmons RH, et al.: Molecular and clinical characteristics of MSH6 variants: an analysis of 25 index carriers of a germline variant. Am J Hum Genet 70 (1): 26-37, 2002.11709755 21606064
Ramsoekh D, Wagner A, van Leerdam ME, et al.: A high incidence of MSH6 mutations in Amsterdam criteria II-negative families tested in a diagnostic setting. Gut 57 (11): 1539-44, 2008.18625694
Peltomäki P, Vasen H: Mutations associated with HNPCC predisposition -- Update of ICG-HNPCC/INSiGHT mutation database. Dis Markers 20 (4-5): 269-76, 2004.15528792
Kolodner RD, Tytell JD, Schmeits JL, et al.: Germ-line msh6 mutations in colorectal cancer families. Cancer Res 59 (20): 5068-74, 1999.10537275 20005667
Peterlongo P, Nafa K, Lerman GS, et al.: MSH6 germline mutations are rare in colorectal cancer families. Int J Cancer 107 (4): 571-9, 2003.14520694
Hendriks YM, Wagner A, Morreau H, et al.: Cancer risk in hereditary nonpolyposis colorectal cancer due to MSH6 mutations: impact on counseling and surveillance. Gastroenterology 127 (1): 17-25, 2004.15236168
Goodenberger ML, Thomas BC, Riegert-Johnson D, et al.: PMS2 monoallelic mutation carriers: the known unknown. Genet Med 18 (1): 13-9, 2016.25856668
Hendriks YM, Jagmohan-Changur S, van der Klift HM, et al.: Heterozygous mutations in PMS2 cause hereditary nonpolyposis colorectal carcinoma (Lynch syndrome). Gastroenterology 130 (2): 312-22, 2006.16472587
Truninger K, Menigatti M, Luz J, et al.: Immunohistochemical analysis reveals high frequency of PMS2 defects in colorectal cancer. Gastroenterology 128 (5): 1160-71, 2005.15887099
Senter L, Clendenning M, Sotamaa K, et al.: The clinical phenotype of Lynch syndrome due to germ-line PMS2 mutations. Gastroenterology 135 (2): 419-28, 2008.18602922
ten Broeke SW, Brohet RM, Tops CM, et al.: Lynch syndrome caused by germline PMS2 mutations: delineating the cancer risk. J Clin Oncol 33 (4): 319-25, 2015.25512458
Ten Broeke SW, van der Klift HM, Tops CMJ, et al.: Cancer Risks for PMS2-Associated Lynch Syndrome. J Clin Oncol 36 (29): 2961-2968, 2018.30161022
Møller P, Seppälä T, Bernstein I, et al.: Incidence of and survival after subsequent cancers in carriers of pathogenic MMR variants with previous cancer: a report from the prospective Lynch syndrome database. Gut 66 (9): 1657-1664, 2017.27261338
Møller P, Seppälä TT, Bernstein I, et al.: Cancer risk and survival in path_MMR carriers by gene and gender up to 75 years of age: a report from the Prospective Lynch Syndrome Database. Gut 67 (7): 1306-1316, 2018.28754778
Engel C, Vasen HF, Seppälä T, et al.: No Difference in Colorectal Cancer Incidence or Stage at Detection by Colonoscopy Among 3 Countries With Different Lynch Syndrome Surveillance Policies. Gastroenterology 155 (5): 1400-1409.e2, 2018.30063918
Ligtenberg MJ, Kuiper RP, Geurts van Kessel A, et al.: EPCAM deletion carriers constitute a unique subgroup of Lynch syndrome patients. Fam Cancer 12 (2): 169-74, 2013.23264089
Kempers MJ, Kuiper RP, Ockeloen CW, et al.: Risk of colorectal and endometrial cancers in EPCAM deletion-positive Lynch syndrome: a cohort study. Lancet Oncol 12 (1): 49-55, 2011.21145788
Lynch HT, Riegert-Johnson DL, Snyder C, et al.: Lynch syndrome-associated extracolonic tumors are rare in two extended families with the same EPCAM deletion. Am J Gastroenterol 106 (10): 1829-36, 2011.21769135
Dowty JG, Win AK, Buchanan DD, et al.: Cancer risks for MLH1 and MSH2 mutation carriers. Hum Mutat 34 (3): 490-7, 2013.23255516
International Mismatch Repair Consortium: Variation in the risk of colorectal cancer in families with Lynch syndrome: a retrospective cohort study. Lancet Oncol 22 (7): 1014-1022, 2021.34111421
Desai DC, Lockman JC, Chadwick RB, et al.: Recurrent germline mutation in MSH2 arises frequently de novo. J Med Genet 37 (9): 646-52, 2000.10978353
Nyström-Lahti M, Kristo P, Nicolaides NC, et al.: Founding mutations and Alu-mediated recombination in hereditary colon cancer. Nat Med 1 (11): 1203-6, 1995.7584997
Moisio AL, Sistonen P, Weissenbach J, et al.: Age and origin of two common MLH1 mutations predisposing to hereditary colon cancer. Am J Hum Genet 59 (6): 1243-51, 1996.8940269
Caluseriu O, Di Gregorio C, Lucci-Cordisco E, et al.: A founder MLH1 mutation in families from the districts of Modena and Reggio-Emilia in northern Italy with hereditary non-polyposis colorectal cancer associated with protein elongation and instability. J Med Genet 41 (3): e34, 2004.14985405
Chan TL, Chan YW, Ho JW, et al.: MSH2 c.1452-1455delAATG is a founder mutation and an important cause of hereditary nonpolyposis colorectal cancer in the southern Chinese population. Am J Hum Genet 74 (5): 1035-42, 2004.15042510
Clendenning M, Baze ME, Sun S, et al.: Origins and prevalence of the American Founder Mutation of MSH2. Cancer Res 68 (7): 2145-53, 2008.18381419
Dominguez-Valentin M, Nilbert M, Wernhoff P, et al.: Mutation spectrum in South American Lynch syndrome families. Hered Cancer Clin Pract 11 (1): 18, 2013.24344984
Cruz-Correa M, Diaz-Algorri Y, Pérez-Mayoral J, et al.: Clinical characterization and mutation spectrum in Caribbean Hispanic families with Lynch syndrome. Fam Cancer 14 (3): 415-25, 2015.25782445
Sunga AY, Ricker C, Espenschied CR, et al.: Spectrum of mismatch repair gene mutations and clinical presentation of Hispanic individuals with Lynch syndrome. Cancer Genet 212-213: 1-7, 2017.28449805
Ricker CN, Hanna DL, Peng C, et al.: DNA mismatch repair deficiency and hereditary syndromes in Latino patients with colorectal cancer. Cancer 123 (19): 3732-3743, 2017.28640387
Guindalini RS, Win AK, Gulden C, et al.: Mutation spectrum and risk of colorectal cancer in African American families with Lynch syndrome. Gastroenterology 149 (6): 1446-53, 2015.26248088
Parry S, Win AK, Parry B, et al.: Metachronous colorectal cancer risk for mismatch repair gene mutation carriers: the advantage of more extensive colon surgery. Gut 60 (7): 950-7, 2011.21193451
Signoroni S, Piozzi GN, Ricci MT, et al.: Risk factors for metachronous colorectal cancer in Lynch syndrome patients: a registry-based observational mono-institutional study cohort. Int J Clin Oncol 25 (9): 1644-1652, 2020.32430733
Watson P, Vasen HF, Mecklin JP, et al.: The risk of endometrial cancer in hereditary nonpolyposis colorectal cancer. Am J Med 96 (6): 516-20, 1994.8017449 94288076
Watson P, Lynch HT: Extracolonic cancer in hereditary nonpolyposis colorectal cancer. Cancer 71 (3): 677-85, 1993.8431847 93161233
Voskuil DW, Vasen HF, Kampman E, et al.: Colorectal cancer risk in HNPCC families: development during lifetime and in successive generations. National Collaborative Group on HNPCC. Int J Cancer 72 (2): 205-9, 1997.9219821 97363528
Heinimann K, Müller H, Weber W, et al.: Disease expression in Swiss hereditary non-polyposis colorectal cancer (HNPCC) kindreds. Int J Cancer 74 (3): 281-5, 1997.9221805 97364856
Lu KH, Dinh M, Kohlmann W, et al.: Gynecologic cancer as a "sentinel cancer" for women with hereditary nonpolyposis colorectal cancer syndrome. Obstet Gynecol 105 (3): 569-74, 2005.15738026
Tan YY, McGaughran J, Ferguson K, et al.: Improving identification of lynch syndrome patients: a comparison of research data with clinical records. Int J Cancer 132 (12): 2876-83, 2013.23225370
Win AK, Young JP, Lindor NM, et al.: Colorectal and other cancer risks for carriers and noncarriers from families with a DNA mismatch repair gene mutation: a prospective cohort study. J Clin Oncol 30 (9): 958-64, 2012.22331944
Win AK, Lindor NM, Winship I, et al.: Risks of colorectal and other cancers after endometrial cancer for women with Lynch syndrome. J Natl Cancer Inst 105 (4): 274-9, 2013.23385444
Broaddus RR, Lynch HT, Chen LM, et al.: Pathologic features of endometrial carcinoma associated with HNPCC: a comparison with sporadic endometrial carcinoma. Cancer 106 (1): 87-94, 2006.16323174
Vasen HF, Offerhaus GJ, den Hartog Jager FC, et al.: The tumour spectrum in hereditary non-polyposis colorectal cancer: a study of 24 kindreds in the Netherlands. Int J Cancer 46 (1): 31-4, 1990.2365499 90307315
Aarnio M, Mecklin JP, Aaltonen LA, et al.: Life-time risk of different cancers in hereditary non-polyposis colorectal cancer (HNPCC) syndrome. Int J Cancer 64 (6): 430-3, 1995.8550246 96144800
Ketabi Z, Bartuma K, Bernstein I, et al.: Ovarian cancer linked to Lynch syndrome typically presents as early-onset, non-serous epithelial tumors. Gynecol Oncol 121 (3): 462-5, 2011.21388660
Borelli I, Casalis Cavalchini GC, Del Peschio S, et al.: A founder MLH1 mutation in Lynch syndrome families from Piedmont, Italy, is associated with an increased risk of pancreatic tumours and diverse immunohistochemical patterns. Fam Cancer 13 (3): 401-13, 2014.24802709
Raymond VM, Mukherjee B, Wang F, et al.: Elevated risk of prostate cancer among men with Lynch syndrome. J Clin Oncol 31 (14): 1713-8, 2013.23530095
Raymond VM, Everett JN, Furtado LV, et al.: Adrenocortical carcinoma is a lynch syndrome-associated cancer. J Clin Oncol 31 (24): 3012-8, 2013.23752102
Haraldsdottir S, Hampel H, Wei L, et al.: Prostate cancer incidence in males with Lynch syndrome. Genet Med 16 (7): 553-7, 2014.24434690
Bapat B, Xia L, Madlensky L, et al.: The genetic basis of Muir-Torre syndrome includes the hMLH1 locus. Am J Hum Genet 59 (3): 736-9, 1996.8751876 96354569
Lynch HT, Lynch PM, Pester J, et al.: The cancer family syndrome. Rare cutaneous phenotypic linkage of Torre's syndrome. Arch Intern Med 141 (5): 607-11, 1981.7224741 81183154
Suspiro A, Fidalgo P, Cravo M, et al.: The Muir-Torre syndrome: a rare variant of hereditary nonpolyposis colorectal cancer associated with hMSH2 mutation. Am J Gastroenterol 93 (9): 1572-4, 1998.9732950
Kruse R, Rütten A, Lamberti C, et al.: Muir-Torre phenotype has a frequency of DNA mismatch-repair-gene mutations similar to that in hereditary nonpolyposis colorectal cancer families defined by the Amsterdam criteria. Am J Hum Genet 63 (1): 63-70, 1998.9634524
South CD, Hampel H, Comeras I, et al.: The frequency of Muir-Torre syndrome among Lynch syndrome families. J Natl Cancer Inst 100 (4): 277-81, 2008.18270343
Kacerovska D, Cerna K, Martinek P, et al.: MSH6 mutation in a family affected by Muir-Torre syndrome. Am J Dermatopathol 34 (6): 648-52, 2012.22814321
Tavakkol Z, Keller JJ, Furmanczyk PS, et al.: Germline mutation in MSH6 associated with multiple malignant neoplasms in a patient With Muir-Torre syndrome. J Clin Oncol 30 (22): e195-8, 2012.22734033
Murphy HR, Armstrong R, Cairns D, et al.: Muir-Torre Syndrome: expanding the genotype and phenotype--a further family with a MSH6 mutation. Fam Cancer 7 (3): 255-7, 2008.18236172
Arnold A, Payne S, Fisher S, et al.: An individual with Muir-Torre syndrome found to have a pathogenic MSH6 gene mutation. Fam Cancer 6 (3): 317-21, 2007.17323113
Mangold E, Rahner N, Friedrichs N, et al.: MSH6 mutation in Muir-Torre syndrome: could this be a rare finding? Br J Dermatol 156 (1): 158-62, 2007.17199584
Kastrinos F, Stoffel EM, Balmaña J, et al.: Phenotype comparison of MLH1 and MSH2 mutation carriers in a cohort of 1,914 individuals undergoing clinical genetic testing in the United States. Cancer Epidemiol Biomarkers Prev 17 (8): 2044-51, 2008.18708397
Lamba AR, Moore AY, Moore T, et al.: Defective DNA mismatch repair activity is common in sebaceous neoplasms, and may be an ineffective approach to screen for Lynch syndrome. Fam Cancer 14 (2): 259-64, 2015.25637498
Syngal S, Brand RE, Church JM, et al.: ACG clinical guideline: Genetic testing and management of hereditary gastrointestinal cancer syndromes. Am J Gastroenterol 110 (2): 223-62; quiz 263, 2015.25645574
Howlader N, Noone AM, Krapcho M, et al., eds.: SEER Cancer Statistics Review (CSR) 1975-2014. National Cancer Institute. Also available online (https://seer.cancer.gov/csr/1975_2014/). Last accessed May 24, 2024.
Jenkins MA, Baglietto L, Dowty JG, et al.: Cancer risks for mismatch repair gene mutation carriers: a population-based early onset case-family study. Clin Gastroenterol Hepatol 4 (4): 489-98, 2006.16616355
Barrow E, Robinson L, Alduaij W, et al.: Cumulative lifetime incidence of extracolonic cancers in Lynch syndrome: a report of 121 families with proven mutations. Clin Genet 75 (2): 141-9, 2009.19215248
Engel C, Loeffler M, Steinke V, et al.: Risks of less common cancers in proven mutation carriers with lynch syndrome. J Clin Oncol 30 (35): 4409-15, 2012.23091106
Watson P, Vasen HF, Mecklin JP, et al.: The risk of extra-colonic, extra-endometrial cancer in the Lynch syndrome. Int J Cancer 123 (2): 444-9, 2008.18398828
Capelle LG, Van Grieken NC, Lingsma HF, et al.: Risk and epidemiological time trends of gastric cancer in Lynch syndrome carriers in the Netherlands. Gastroenterology 138 (2): 487-92, 2010.19900449
Aarnio M, Sankila R, Pukkala E, et al.: Cancer risk in mutation carriers of DNA-mismatch-repair genes. Int J Cancer 81 (2): 214-8, 1999.10188721 99202604
van der Post RS, Kiemeney LA, Ligtenberg MJ, et al.: Risk of urothelial bladder cancer in Lynch syndrome is increased, in particular among MSH2 mutation carriers. J Med Genet 47 (7): 464-70, 2010.20591884
Cloyd JM, Chun YS, Ikoma N, et al.: Clinical and Genetic Implications of DNA Mismatch Repair Deficiency in Biliary Tract Cancers Associated with Lynch Syndrome. J Gastrointest Cancer 49 (1): 93-96, 2018.29238914
Yang KY, Caughey AB, Little SE, et al.: A cost-effectiveness analysis of prophylactic surgery versus gynecologic surveillance for women from hereditary non-polyposis colorectal cancer (HNPCC) Families. Fam Cancer 10 (3): 535-43, 2011.21538078
Ponti G, Losi L, Pedroni M, et al.: Value of MLH1 and MSH2 mutations in the appearance of Muir-Torre syndrome phenotype in HNPCC patients presenting sebaceous gland tumors or keratoacanthomas. J Invest Dermatol 126 (10): 2302-7, 2006.16826164
Schwartz RA, Torre DP: The Muir-Torre syndrome: a 25-year retrospect. J Am Acad Dermatol 33 (1): 90-104, 1995.7601953
Dunlop MG, Farrington SM, Carothers AD, et al.: Cancer risk associated with germline DNA mismatch repair gene mutations. Hum Mol Genet 6 (1): 105-10, 1997.9002677
Kastrinos F, Mukherjee B, Tayob N, et al.: Risk of pancreatic cancer in families with Lynch syndrome. JAMA 302 (16): 1790-5, 2009.19861671
Jensen UB, Sunde L, Timshel S, et al.: Mismatch repair defective breast cancer in the hereditary nonpolyposis colorectal cancer syndrome. Breast Cancer Res Treat 120 (3): 777-82, 2010.19575290
Shanley S, Fung C, Milliken J, et al.: Breast cancer immunohistochemistry can be useful in triage of some HNPCC families. Fam Cancer 8 (3): 251-5, 2009.19123071
Walsh MD, Buchanan DD, Cummings MC, et al.: Lynch syndrome-associated breast cancers: clinicopathologic characteristics of a case series from the colon cancer family registry. Clin Cancer Res 16 (7): 2214-24, 2010.20215533
Buerki N, Gautier L, Kovac M, et al.: Evidence for breast cancer as an integral part of Lynch syndrome. Genes Chromosomes Cancer 51 (1): 83-91, 2012.22034109
Win AK, Lindor NM, Young JP, et al.: Risks of primary extracolonic cancers following colorectal cancer in lynch syndrome. J Natl Cancer Inst 104 (18): 1363-72, 2012.22933731
Harkness EF, Barrow E, Newton K, et al.: Lynch syndrome caused by MLH1 mutations is associated with an increased risk of breast cancer: a cohort study. J Med Genet 52 (8): 553-6, 2015.26101330
Win AK, Lindor NM, Jenkins MA: Risk of breast cancer in Lynch syndrome: a systematic review. Breast Cancer Res 15 (2): R27, 2013.23510156
Goldberg M, Bell K, Aronson M, et al.: Association between the Lynch syndrome gene MSH2 and breast cancer susceptibility in a Canadian familial cancer registry. J Med Genet 54 (11): 742-746, 2017.28779004
Lu HM, Li S, Black MH, et al.: Association of Breast and Ovarian Cancers With Predisposition Genes Identified by Large-Scale Sequencing. JAMA Oncol 5 (1): 51-57, 2019.30128536
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 1.2021. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2020. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed May 24, 2024.
Ryan S, Jenkins MA, Win AK: Risk of prostate cancer in Lynch syndrome: a systematic review and meta-analysis. Cancer Epidemiol Biomarkers Prev 23 (3): 437-49, 2014.24425144
Pritchard CC, Mateo J, Walsh MF, et al.: Inherited DNA-Repair Gene Mutations in Men with Metastatic Prostate Cancer. N Engl J Med 375 (5): 443-53, 2016.27433846
De Jong AE, Morreau H, Van Puijenbroek M, et al.: The role of mismatch repair gene defects in the development of adenomas in patients with HNPCC. Gastroenterology 126 (1): 42-8, 2004.14699485
Johnson PM, Gallinger S, McLeod RS: Surveillance colonoscopy in individuals at risk for hereditary nonpolyposis colorectal cancer: an evidence-based review. Dis Colon Rectum 49 (1): 80-93; discussion 94-5, 2006.16284887
Lindor NM, Petersen GM, Hadley DW, et al.: Recommendations for the care of individuals with an inherited predisposition to Lynch syndrome: a systematic review. JAMA 296 (12): 1507-17, 2006.17003399
Reitmair AH, Cai JC, Bjerknes M, et al.: MSH2 deficiency contributes to accelerated APC-mediated intestinal tumorigenesis. Cancer Res 56 (13): 2922-6, 1996.8674041 96258209
Järvinen HJ, Aarnio M, Mustonen H, et al.: Controlled 15-year trial on screening for colorectal cancer in families with hereditary nonpolyposis colorectal cancer. Gastroenterology 118 (5): 829-34, 2000.10784581 20247224
Järvinen HJ, Mecklin JP, Sistonen P: Screening reduces colorectal cancer rate in families with hereditary nonpolyposis colorectal cancer. Gastroenterology 108 (5): 1405-11, 1995.7729632 95246973
Engel C, Rahner N, Schulmann K, et al.: Efficacy of annual colonoscopic surveillance in individuals with hereditary nonpolyposis colorectal cancer. Clin Gastroenterol Hepatol 8 (2): 174-82, 2010.19835992
Vasen HF, Abdirahman M, Brohet R, et al.: One to 2-year surveillance intervals reduce risk of colorectal cancer in families with Lynch syndrome. Gastroenterology 138 (7): 2300-6, 2010.20206180
Järvinen HJ, Renkonen-Sinisalo L, Aktán-Collán K, et al.: Ten years after mutation testing for Lynch syndrome: cancer incidence and outcome in mutation-positive and mutation-negative family members. J Clin Oncol 27 (28): 4793-7, 2009.19720893
Lindberg LJ, Wegen-Haitsma W, Ladelund S, et al.: Risk of multiple colorectal cancer development depends on age and subgroup in individuals with hereditary predisposition. Fam Cancer 18 (2): 183-191, 2019.30302651
Hurlstone DP, Karajeh M, Cross SS, et al.: The role of high-magnification-chromoscopic colonoscopy in hereditary nonpolyposis colorectal cancer screening: a prospective "back-to-back" endoscopic study. Am J Gastroenterol 100 (10): 2167-73, 2005.16181364
Lecomte T, Cellier C, Meatchi T, et al.: Chromoendoscopic colonoscopy for detecting preneoplastic lesions in hereditary nonpolyposis colorectal cancer syndrome. Clin Gastroenterol Hepatol 3 (9): 897-902, 2005.16234028
Müller A, Beckmann C, Westphal G, et al.: Prevalence of the mismatch-repair-deficient phenotype in colonic adenomas arising in HNPCC patients: results of a 5-year follow-up study. Int J Colorectal Dis 21 (7): 632-41, 2006.16511680
Yurgelun MB, Goel A, Hornick JL, et al.: Microsatellite instability and DNA mismatch repair protein deficiency in Lynch syndrome colorectal polyps. Cancer Prev Res (Phila) 5 (4): 574-82, 2012.22262812
Monahan KJ, Bradshaw N, Dolwani S, et al.: Guidelines for the management of hereditary colorectal cancer from the British Society of Gastroenterology (BSG)/Association of Coloproctology of Great Britain and Ireland (ACPGBI)/United Kingdom Cancer Genetics Group (UKCGG). Gut 69 (3): 411-444, 2020.31780574
Seppälä TT, Latchford A, Negoi I, et al.: European guidelines from the EHTG and ESCP for Lynch syndrome: an updated third edition of the Mallorca guidelines based on gene and gender. Br J Surg 108 (5): 484-498, 2021.34043773
Stjepanovic N, Moreira L, Carneiro F, et al.: Hereditary gastrointestinal cancers: ESMO Clinical Practice Guidelines for diagnosis, treatment and follow-up†. Ann Oncol 30 (10): 1558-1571, 2019.31378807
Hendriks YM, de Jong AE, Morreau H, et al.: Diagnostic approach and management of Lynch syndrome (hereditary nonpolyposis colorectal carcinoma): a guide for clinicians. CA Cancer J Clin 56 (4): 213-25, 2006 Jul-Aug.16870997
Dove-Edwin I, Boks D, Goff S, et al.: The outcome of endometrial carcinoma surveillance by ultrasound scan in women at risk of hereditary nonpolyposis colorectal carcinoma and familial colorectal carcinoma. Cancer 94 (6): 1708-12, 2002.11920532 21916623
Rijcken FE, Mourits MJ, Kleibeuker JH, et al.: Gynecologic screening in hereditary nonpolyposis colorectal cancer. Gynecol Oncol 91 (1): 74-80, 2003.14529665
Renkonen-Sinisalo L, Bützow R, Leminen A, et al.: Surveillance for endometrial cancer in hereditary nonpolyposis colorectal cancer syndrome. Int J Cancer 120 (4): 821-4, 2007.17096354
Yang K, Allen B, Conrad P, et al.: Awareness of gynecologic surveillance in women from hereditary non-polyposis colorectal cancer families. Fam Cancer 5 (4): 405-9, 2006.16937235
Collins VR, Meiser B, Ukoumunne OC, et al.: The impact of predictive genetic testing for hereditary nonpolyposis colorectal cancer: three years after testing. Genet Med 9 (5): 290-7, 2007.17505206
Schmeler KM, Lynch HT, Chen LM, et al.: Prophylactic surgery to reduce the risk of gynecologic cancers in the Lynch syndrome. N Engl J Med 354 (3): 261-9, 2006.16421367
Kwon JS, Sun CC, Peterson SK, et al.: Cost-effectiveness analysis of prevention strategies for gynecologic cancers in Lynch syndrome. Cancer 113 (2): 326-35, 2008.18506736
Aarnio M, Salovaara R, Aaltonen LA, et al.: Features of gastric cancer in hereditary non-polyposis colorectal cancer syndrome. Int J Cancer 74 (5): 551-5, 1997.9355980 98016057
Farha N, Hrabe J, Sleiman J, et al.: Clinically actionable findings on surveillance EGD in asymptomatic patients with Lynch syndrome. Gastrointest Endosc 95 (1): 105-114, 2022.34252420
Canto MI, Harinck F, Hruban RH, et al.: International Cancer of the Pancreas Screening (CAPS) Consortium summit on the management of patients with increased risk for familial pancreatic cancer. Gut 62 (3): 339-47, 2013.23135763
Burn J, Gerdes AM, Macrae F, et al.: Long-term effect of aspirin on cancer risk in carriers of hereditary colorectal cancer: an analysis from the CAPP2 randomised controlled trial. Lancet 378 (9809): 2081-7, 2011.22036019
Burn J, Bishop DT, Mecklin JP, et al.: Effect of aspirin or resistant starch on colorectal neoplasia in the Lynch syndrome. N Engl J Med 359 (24): 2567-78, 2008.19073976
Burn J, Sheth H, Elliott F, et al.: Cancer prevention with aspirin in hereditary colorectal cancer (Lynch syndrome), 10-year follow-up and registry-based 20-year data in the CAPP2 study: a double-blind, randomised, placebo-controlled trial. Lancet 395 (10240): 1855-1863, 2020.32534647
Mathers JC, Elliott F, Macrae F, et al.: Cancer Prevention with Resistant Starch in Lynch Syndrome Patients in the CAPP2-Randomized Placebo Controlled Trial: Planned 10-Year Follow-up. Cancer Prev Res (Phila) 15 (9): 623-634, 2022.35878732
Yurgelun MB, Chan AT: Aspirin for Lynch syndrome: a legacy of prevention. Lancet 395 (10240): 1817-1818, 2020.32534636
Movahedi M, Bishop DT, Macrae F, et al.: Obesity, Aspirin, and Risk of Colorectal Cancer in Carriers of Hereditary Colorectal Cancer: A Prospective Investigation in the CAPP2 Study. J Clin Oncol 33 (31): 3591-7, 2015.26282643
Burn J, Mathers JC, Bishop DT: Chemoprevention in Lynch syndrome. Fam Cancer 12 (4): 707-18, 2013.23880960
Ait Ouakrim D, Dashti SG, Chau R, et al.: Aspirin, Ibuprofen, and the Risk of Colorectal Cancer in Lynch Syndrome. J Natl Cancer Inst 107 (9): , 2015.26109217
Reyes-Uribe L, Wu W, Gelincik O, et al.: Naproxen chemoprevention promotes immune activation in Lynch syndrome colorectal mucosa. Gut 70 (3): 555-566, 2021.32641470
de Vos tot Nederveen Cappel WH, Buskens E, van Duijvendijk P, et al.: Decision analysis in the surgical treatment of colorectal cancer due to a mismatch repair gene defect. Gut 52 (12): 1752-5, 2003.14633956
Natarajan N, Watson P, Silva-Lopez E, et al.: Comparison of extended colectomy and limited resection in patients with Lynch syndrome. Dis Colon Rectum 53 (1): 77-82, 2010.20010355
Maeda T, Cannom RR, Beart RW, et al.: Decision model of segmental compared with total abdominal colectomy for colon cancer in hereditary nonpolyposis colorectal cancer. J Clin Oncol 28 (7): 1175-80, 2010.20124166
Hiatt MJ, Casey MJ, Lynch HT, et al.: Efficacy of proximal colectomy for surgical management of right-sided first colorectal cancer in Lynch Syndrome mutation carriers. Am J Surg 216 (1): 99-105, 2018.29153248
Rodríguez-Bigas MA, Vasen HF, Pekka-Mecklin J, et al.: Rectal cancer risk in hereditary nonpolyposis colorectal cancer after abdominal colectomy. International Collaborative Group on HNPCC. Ann Surg 225 (2): 202-7, 1997.9065297
de Rosa N, Rodriguez-Bigas MA, Chang GJ, et al.: DNA Mismatch Repair Deficiency in Rectal Cancer: Benchmarking Its Impact on Prognosis, Neoadjuvant Response Prediction, and Clinical Cancer Genetics. J Clin Oncol 34 (25): 3039-46, 2016.27432916
Lee JS, Petrelli NJ, Rodriguez-Bigas MA: Rectal cancer in hereditary nonpolyposis colorectal cancer. Am J Surg 181 (3): 207-10, 2001.11376572
Kalady MF, Lipman J, McGannon E, et al.: Risk of colonic neoplasia after proctectomy for rectal cancer in hereditary nonpolyposis colorectal cancer. Ann Surg 255 (6): 1121-5, 2012.22549751
Olsen KØ, Juul S, Bülow S, et al.: Female fecundity before and after operation for familial adenomatous polyposis. Br J Surg 90 (2): 227-31, 2003.12555301 22441780
Nieuwenhuis MH, Douma KF, Bleiker EM, et al.: Female fertility after colorectal surgery for familial adenomatous polyposis: a nationwide cross-sectional study. Ann Surg 252 (2): 341-4, 2010.20622653
Guillem JG, Wood WC, Moley JF, et al.: ASCO/SSO review of current role of risk-reducing surgery in common hereditary cancer syndromes. J Clin Oncol 24 (28): 4642-60, 2006.17008706
Vasen HF, Blanco I, Aktan-Collan K, et al.: Revised guidelines for the clinical management of Lynch syndrome (HNPCC): recommendations by a group of European experts. Gut 62 (6): 812-23, 2013.23408351
Rodriguez-Bigas MA, Möeslein G: Surgical treatment of hereditary nonpolyposis colorectal cancer (HNPCC, Lynch syndrome). Fam Cancer 12 (2): 295-300, 2013.23508345
Samowitz WS, Curtin K, Ma KN, et al.: Microsatellite instability in sporadic colon cancer is associated with an improved prognosis at the population level. Cancer Epidemiol Biomarkers Prev 10 (9): 917-23, 2001.11535541
Koopman M, Kortman GA, Mekenkamp L, et al.: Deficient mismatch repair system in patients with sporadic advanced colorectal cancer. Br J Cancer 100 (2): 266-73, 2009.19165197
Popat S, Hubner R, Houlston RS: Systematic review of microsatellite instability and colorectal cancer prognosis. J Clin Oncol 23 (3): 609-18, 2005.15659508
Hutchins G, Southward K, Handley K, et al.: Value of mismatch repair, KRAS, and BRAF mutations in predicting recurrence and benefits from chemotherapy in colorectal cancer. J Clin Oncol 29 (10): 1261-70, 2011.21383284
Roth AD, Tejpar S, Delorenzi M, et al.: Prognostic role of KRAS and BRAF in stage II and III resected colon cancer: results of the translational study on the PETACC-3, EORTC 40993, SAKK 60-00 trial. J Clin Oncol 28 (3): 466-74, 2010.20008640
Liu GC, Liu RY, Yan JP, et al.: The Heterogeneity Between Lynch-Associated and Sporadic MMR Deficiency in Colorectal Cancers. J Natl Cancer Inst 110 (9): 975-984, 2018.29471527
Boland CR, Goel A: Microsatellite instability in colorectal cancer. Gastroenterology 138 (6): 2073-2087.e3, 2010.20420947
Hawn MT, Umar A, Carethers JM, et al.: Evidence for a connection between the mismatch repair system and the G2 cell cycle checkpoint. Cancer Res 55 (17): 3721-5, 1995.7641183
Carethers JM, Hawn MT, Chauhan DP, et al.: Competency in mismatch repair prohibits clonal expansion of cancer cells treated with N-methyl-N'-nitro-N-nitrosoguanidine. J Clin Invest 98 (1): 199-206, 1996.8690794
Aebi S, Kurdi-Haidar B, Gordon R, et al.: Loss of DNA mismatch repair in acquired resistance to cisplatin. Cancer Res 56 (13): 3087-90, 1996.8674066
Carethers JM, Chauhan DP, Fink D, et al.: Mismatch repair proficiency and in vitro response to 5-fluorouracil. Gastroenterology 117 (1): 123-31, 1999.10381918
Elsaleh H, Joseph D, Grieu F, et al.: Association of tumour site and sex with survival benefit from adjuvant chemotherapy in colorectal cancer. Lancet 355 (9217): 1745-50, 2000.10832824
Ribic CM, Sargent DJ, Moore MJ, et al.: Tumor microsatellite-instability status as a predictor of benefit from fluorouracil-based adjuvant chemotherapy for colon cancer. N Engl J Med 349 (3): 247-57, 2003.12867608
Sinicrope FA, Foster NR, Thibodeau SN, et al.: DNA mismatch repair status and colon cancer recurrence and survival in clinical trials of 5-fluorouracil-based adjuvant therapy. J Natl Cancer Inst 103 (11): 863-75, 2011.21597022
Fink D, Nebel S, Aebi S, et al.: The role of DNA mismatch repair in platinum drug resistance. Cancer Res 56 (21): 4881-6, 1996.8895738
Tougeron D, Mouillet G, Trouilloud I, et al.: Efficacy of Adjuvant Chemotherapy in Colon Cancer With Microsatellite Instability: A Large Multicenter AGEO Study. J Natl Cancer Inst 108 (7): , 2016.26839356
Kim JE, Hong YS, Kim HJ, et al.: Microsatellite Instability was not Associated with Survival in Stage III Colon Cancer Treated with Adjuvant Chemotherapy of Oxaliplatin and Infusional 5-Fluorouracil and Leucovorin (FOLFOX). Ann Surg Oncol 24 (5): 1289-1294, 2017.27853901
Oh SY, Kim DY, Kim YB, et al.: Oncologic outcomes after adjuvant chemotherapy using FOLFOX in MSI-H sporadic stage III colon cancer. World J Surg 37 (10): 2497-503, 2013.23754140
Le DT, Uram JN, Wang H, et al.: PD-1 Blockade in Tumors with Mismatch-Repair Deficiency. N Engl J Med 372 (26): 2509-20, 2015.26028255
Overman MJ, McDermott R, Leach JL, et al.: Nivolumab in patients with metastatic DNA mismatch repair-deficient or microsatellite instability-high colorectal cancer (CheckMate 142): an open-label, multicentre, phase 2 study. Lancet Oncol 18 (9): 1182-1191, 2017.28734759
André T, Shiu KK, Kim TW, et al.: Pembrolizumab in Microsatellite-Instability-High Advanced Colorectal Cancer. N Engl J Med 383 (23): 2207-2218, 2020.33264544
Diaz LA, Shiu KK, Kim TW, et al.: Pembrolizumab versus chemotherapy for microsatellite instability-high or mismatch repair-deficient metastatic colorectal cancer (KEYNOTE-177): final analysis of a randomised, open-label, phase 3 study. Lancet Oncol 23 (5): 659-670, 2022.35427471
Overman MJ, Lonardi S, Wong KYM, et al.: Durable Clinical Benefit With Nivolumab Plus Ipilimumab in DNA Mismatch Repair-Deficient/Microsatellite Instability-High Metastatic Colorectal Cancer. J Clin Oncol 36 (8): 773-779, 2018.29355075
Ludford K, Cohen R, Svrcek M, et al.: Pathological Tumor Response Following Immune Checkpoint Blockade for Deficient Mismatch Repair Advanced Colorectal Cancer. J Natl Cancer Inst 113 (2): 208-211, 2021.32294214
Zhou XP, Waite KA, Pilarski R, et al.: Germline PTEN promoter mutations and deletions in Cowden/Bannayan-Riley-Ruvalcaba syndrome result in aberrant PTEN protein and dysregulation of the phosphoinositol-3-kinase/Akt pathway. Am J Hum Genet 73 (2): 404-11, 2003.12844284
Mester J, Eng C: When overgrowth bumps into cancer: the PTEN-opathies. Am J Med Genet C Semin Med Genet 163C (2): 114-21, 2013.23613428
Eng C: PTEN: one gene, many syndromes. Hum Mutat 22 (3): 183-98, 2003.12938083
Marsh DJ, Kum JB, Lunetta KL, et al.: PTEN mutation spectrum and genotype-phenotype correlations in Bannayan-Riley-Ruvalcaba syndrome suggest a single entity with Cowden syndrome. Hum Mol Genet 8 (8): 1461-72, 1999.10400993
Pilarski R, Eng C: Will the real Cowden syndrome please stand up (again)? Expanding mutational and clinical spectra of the PTEN hamartoma tumour syndrome. J Med Genet 41 (5): 323-6, 2004.15121767
Eng C: PTEN Hamartoma Tumor Syndrome (PHTS). In: Adam MP, Feldman J, Mirzaa GM, et al., eds.: GeneReviews. University of Washington, Seattle, 1993-2024, pp. Available online (https://www.ncbi.nlm.nih.gov/books/NBK1488/). Last accessed May 8, 2025.
Pilarski R, Burt R, Kohlman W, et al.: Cowden syndrome and the PTEN hamartoma tumor syndrome: systematic review and revised diagnostic criteria. J Natl Cancer Inst 105 (21): 1607-16, 2013.24136893
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2022. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2022. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed May 24, 2024.
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Ngeow J, Liu C, Zhou K, et al.: Detecting Germline PTEN Mutations Among At-Risk Patients With Cancer: An Age- and Sex-Specific Cost-Effectiveness Analysis. J Clin Oncol 33 (23): 2537-44, 2015.26169622
Tan MH, Mester JL, Ngeow J, et al.: Lifetime cancer risks in individuals with germline PTEN mutations. Clin Cancer Res 18 (2): 400-7, 2012.22252256
Bubien V, Bonnet F, Brouste V, et al.: High cumulative risks of cancer in patients with PTEN hamartoma tumour syndrome. J Med Genet 50 (4): 255-63, 2013.23335809
Heald B, Mester J, Rybicki L, et al.: Frequent gastrointestinal polyps and colorectal adenocarcinomas in a prospective series of PTEN mutation carriers. Gastroenterology 139 (6): 1927-33, 2010.20600018
Peutz JL: Very remarkable case of familial polyposis of mucous membrane of intestinal tract and nasopharynx accompanied by peculiar pigmentations of skin and mucous membrane. Ned Tijdschr Geneeskd 10: 134-146, 1921.
Jeghers H, McKusick VA, Katz KH: Generalized intestinal polyposis and melanin spots of the oral mucosa, lips and digits; a syndrome of diagnostic significance. N Engl J Med 241 (26): 1031-6, 1949.15398245
Spigelman AD, Murday V, Phillips RK: Cancer and the Peutz-Jeghers syndrome. Gut 30 (11): 1588-90, 1989.2599445 90093096
Aretz S, Stienen D, Uhlhaas S, et al.: High proportion of large genomic STK11 deletions in Peutz-Jeghers syndrome. Hum Mutat 26 (6): 513-9, 2005.16287113
Hemminki A, Markie D, Tomlinson I, et al.: A serine/threonine kinase gene defective in Peutz-Jeghers syndrome. Nature 391 (6663): 184-7, 1998.9428765 98089041
Jenne DE, Reimann H, Nezu J, et al.: Peutz-Jeghers syndrome is caused by mutations in a novel serine threonine kinase. Nat Genet 18 (1): 38-43, 1998.9425897 98085866
Boudeau J, Kieloch A, Alessi DR, et al.: Functional analysis of LKB1/STK11 mutants and two aberrant isoforms found in Peutz-Jeghers Syndrome patients. Hum Mutat 21 (2): 172, 2003.12552571 22439684
Lim W, Hearle N, Shah B, et al.: Further observations on LKB1/STK11 status and cancer risk in Peutz-Jeghers syndrome. Br J Cancer 89 (2): 308-13, 2003.12865922
Giardiello FM, Brensinger JD, Tersmette AC, et al.: Very high risk of cancer in familial Peutz-Jeghers syndrome. Gastroenterology 119 (6): 1447-53, 2000.11113065 20565550
Lim W, Olschwang S, Keller JJ, et al.: Relative frequency and morphology of cancers in STK11 mutation carriers. Gastroenterology 126 (7): 1788-94, 2004.15188174
van Lier MG, Wagner A, Mathus-Vliegen EM, et al.: High cancer risk in Peutz-Jeghers syndrome: a systematic review and surveillance recommendations. Am J Gastroenterol 105 (6): 1258-64; author reply 1265, 2010.20051941
Srivatsa PJ, Keeney GL, Podratz KC: Disseminated cervical adenoma malignum and bilateral ovarian sex cord tumors with annular tubules associated with Peutz-Jeghers syndrome. Gynecol Oncol 53 (2): 256-64, 1994.8188091
Scully RE: Sex cord tumor with annular tubules a distinctive ovarian tumor of the Peutz-Jeghers syndrome. Cancer 25 (5): 1107-21, 1970.5429475 70236106
Westerman AM, Entius MM, de Baar E, et al.: Peutz-Jeghers syndrome: 78-year follow-up of the original family. Lancet 353 (9160): 1211-5, 1999.10217080
Mehenni H, Resta N, Park JG, et al.: Cancer risks in LKB1 germline mutation carriers. Gut 55 (7): 984-90, 2006.16407375
Gruber SB, Entius MM, Petersen GM, et al.: Pathogenesis of adenocarcinoma in Peutz-Jeghers syndrome. Cancer Res 58 (23): 5267-70, 1998.9850045 99065297
Wang ZJ, Ellis I, Zauber P, et al.: Allelic imbalance at the LKB1 (STK11) locus in tumours from patients with Peutz-Jeghers' syndrome provides evidence for a hamartoma-(adenoma)-carcinoma sequence. J Pathol 188 (1): 9-13, 1999.10398133
Miyoshi H, Nakau M, Ishikawa TO, et al.: Gastrointestinal hamartomatous polyposis in Lkb1 heterozygous knockout mice. Cancer Res 62 (8): 2261-6, 2002.11956081
Nakau M, Miyoshi H, Seldin MF, et al.: Hepatocellular carcinoma caused by loss of heterozygosity in Lkb1 gene knockout mice. Cancer Res 62 (16): 4549-53, 2002.12183403
Takeda H, Miyoshi H, Kojima Y, et al.: Accelerated onsets of gastric hamartomas and hepatic adenomas/carcinomas in Lkb1+/-p53-/- compound mutant mice. Oncogene 25 (12): 1816-20, 2006.16278673
Amos CI, Keitheri-Cheteri MB, Sabripour M, et al.: Genotype-phenotype correlations in Peutz-Jeghers syndrome. J Med Genet 41 (5): 327-33, 2004.15121768
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 2.2023 . Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed March 13, 2024.
Boland CR, Idos GE, Durno C, et al.: Diagnosis and Management of Cancer Risk in the Gastrointestinal Hamartomatous Polyposis Syndromes: Recommendations From the US Multi-Society Task Force on Colorectal Cancer. Gastroenterology 162 (7): 2063-2085, 2022.35487791
Urquhart P, Grimpen F, Lim GJ, et al.: Capsule endoscopy versus magnetic resonance enterography for the detection of small bowel polyps in Peutz-Jeghers syndrome. Fam Cancer 13 (2): 249-55, 2014.24509884
Latchford AR, Neale K, Phillips RK, et al.: Juvenile polyposis syndrome: a study of genotype, phenotype, and long-term outcome. Dis Colon Rectum 55 (10): 1038-43, 2012.22965402
Veale AM, McColl I, Bussey HJ, et al.: Juvenile polyposis coli. J Med Genet 3 (1): 5-16, 1966.5911834 67001629
Chow E, Macrae F: A review of juvenile polyposis syndrome. J Gastroenterol Hepatol 20 (11): 1634-40, 2005.16246179
Jass JR, Williams CB, Bussey HJ, et al.: Juvenile polyposis--a precancerous condition. Histopathology 13 (6): 619-30, 1988.2853131
Howe JR, Bair JL, Sayed MG, et al.: Germline mutations of the gene encoding bone morphogenetic protein receptor 1A in juvenile polyposis. Nat Genet 28 (2): 184-7, 2001.11381269 21275975
Zhou XP, Woodford-Richens K, Lehtonen R, et al.: Germline mutations in BMPR1A/ALK3 cause a subset of cases of juvenile polyposis syndrome and of Cowden and Bannayan-Riley-Ruvalcaba syndromes. Am J Hum Genet 69 (4): 704-11, 2001.11536076 21426344
Aytac E, Sulu B, Heald B, et al.: Genotype-defined cancer risk in juvenile polyposis syndrome. Br J Surg 102 (1): 114-8, 2015.25389115
Brosens LA, van Hattem A, Hylind LM, et al.: Risk of colorectal cancer in juvenile polyposis. Gut 56 (7): 965-7, 2007.17303595
MacFarland SP, Ebrahimzadeh JE, Zelley K, et al.: Phenotypic Differences in Juvenile Polyposis Syndrome With or Without a Disease-causing SMAD4/BMPR1A Variant. Cancer Prev Res (Phila) 14 (2): 215-222, 2021.33097490
Gallione CJ, Repetto GM, Legius E, et al.: A combined syndrome of juvenile polyposis and hereditary haemorrhagic telangiectasia associated with mutations in MADH4 (SMAD4). Lancet 363 (9412): 852-9, 2004.15031030
Rosner G, Petel-Galil Y, Laish I, et al.: Adenomatous Polyposis Phenotype in BMPR1A and SMAD4 Variant Carriers. Clin Transl Gastroenterol 13 (10): e00527, 2022.36049049
Aretz S, Stienen D, Uhlhaas S, et al.: High proportion of large genomic deletions and a genotype phenotype update in 80 unrelated families with juvenile polyposis syndrome. J Med Genet 44 (11): 702-9, 2007.17873119
O'Malley M, LaGuardia L, Kalady MF, et al.: The prevalence of hereditary hemorrhagic telangiectasia in juvenile polyposis syndrome. Dis Colon Rectum 55 (8): 886-92, 2012.22810475
Dahdaleh FS, Carr JC, Calva D, et al.: Juvenile polyposis and other intestinal polyposis syndromes with microdeletions of chromosome 10q22-23. Clin Genet 81 (2): 110-6, 2012.21834858
Stanich PP, Pearlman R, Hinton A, et al.: Prevalence of Germline Mutations in Polyposis and Colorectal Cancer-Associated Genes in Patients With Multiple Colorectal Polyps. Clin Gastroenterol Hepatol 17 (10): 2008-2015.e3, 2019.30557735
Yurgelun MB, Hornick JL, Curry VK, et al.: Therapy-associated polyposis as a late sequela of cancer treatment. Clin Gastroenterol Hepatol 12 (6): 1046-50, 2014.24362051
Rigter LS, Kallenberg FG, Bastiaansen B, et al.: A case series of intestinal adenomatous polyposis of unidentified etiology; a late effect of irradiation? BMC Cancer 16 (1): 862, 2016.27821077
Rigter LS, Spaander MCW, Aleman BMP, et al.: High prevalence of advanced colorectal neoplasia and serrated polyposis syndrome in Hodgkin lymphoma survivors. Cancer 125 (6): 990-999, 2019.30561773
Palles C, Cazier JB, Howarth KM, et al.: Germline mutations affecting the proofreading domains of POLE and POLD1 predispose to colorectal adenomas and carcinomas. Nat Genet 45 (2): 136-44, 2013.23263490
Briggs S, Tomlinson I: Germline and somatic polymerase ε and δ mutations define a new class of hypermutated colorectal and endometrial cancers. J Pathol 230 (2): 148-53, 2013.23447401
Cancer Genome Atlas Network: Comprehensive molecular characterization of human colon and rectal cancer. Nature 487 (7407): 330-7, 2012.22810696
Wang F, Zhao Q, Wang YN, et al.: Evaluation of POLE and POLD1 Mutations as Biomarkers for Immunotherapy Outcomes Across Multiple Cancer Types. JAMA Oncol 5 (10): 1504-1506, 2019.31415061
Mur P, García-Mulero S, Del Valle J, et al.: Role of POLE and POLD1 in familial cancer. Genet Med 22 (12): 2089-2100, 2020.32792570
Buchanan DD, Stewart JR, Clendenning M, et al.: Risk of colorectal cancer for carriers of a germ-line mutation in POLE or POLD1. Genet Med 20 (8): 890-895, 2018.29120461
Hamzaoui N, Alarcon F, Leulliot N, et al.: Genetic, structural, and functional characterization of POLE polymerase proofreading variants allows cancer risk prediction. Genet Med 22 (9): 1533-1541, 2020.32424176
Weren RD, Ligtenberg MJ, Kets CM, et al.: A germline homozygous mutation in the base-excision repair gene NTHL1 causes adenomatous polyposis and colorectal cancer. Nat Genet 47 (6): 668-71, 2015.25938944
Broderick P, Dobbins SE, Chubb D, et al.: Validation of Recently Proposed Colorectal Cancer Susceptibility Gene Variants in an Analysis of Families and Patients-a Systematic Review. Gastroenterology 152 (1): 75-77.e4, 2017.27713038
Beck SH, Jelsig AM, Yassin HM, et al.: Intestinal and extraintestinal neoplasms in patients with NTHL1 tumor syndrome: a systematic review. Fam Cancer 21 (4): 453-462, 2022.35292903
Chan JM, Clendenning M, Joseland S, et al.: Rare germline variants in the AXIN2 gene in families with colonic polyposis and colorectal cancer. Fam Cancer 21 (4): 399-413, 2022.34817745
Leclerc J, Beaumont M, Vibert R, et al.: AXIN2 germline testing in a French cohort validates pathogenic variants as a rare cause of predisposition to colorectal polyposis and cancer. Genes Chromosomes Cancer 62 (4): 210-222, 2023.36502525
Lammi L, Arte S, Somer M, et al.: Mutations in AXIN2 cause familial tooth agenesis and predispose to colorectal cancer. Am J Hum Genet 74 (5): 1043-50, 2004.15042511
Marvin ML, Mazzoni SM, Herron CM, et al.: AXIN2-associated autosomal dominant ectodermal dysplasia and neoplastic syndrome. Am J Med Genet A 155A (4): 898-902, 2011.21416598
Rivera B, Perea J, Sánchez E, et al.: A novel AXIN2 germline variant associated with attenuated FAP without signs of oligondontia or ectodermal dysplasia. Eur J Hum Genet 22 (3): 423-6, 2014.23838596
Jaeger E, Leedham S, Lewis A, et al.: Hereditary mixed polyposis syndrome is caused by a 40-kb upstream duplication that leads to increased and ectopic expression of the BMP antagonist GREM1. Nat Genet 44 (6): 699-703, 2012.22561515
Meijers-Heijboer H, Wijnen J, Vasen H, et al.: The CHEK2 1100delC mutation identifies families with a hereditary breast and colorectal cancer phenotype. Am J Hum Genet 72 (5): 1308-14, 2003.12690581 22589977
Cybulski C, Górski B, Huzarski T, et al.: CHEK2 is a multiorgan cancer susceptibility gene. Am J Hum Genet 75 (6): 1131-5, 2004.15492928
de Jong MM, Nolte IM, Te Meerman GJ, et al.: Colorectal cancer and the CHEK2 1100delC mutation. Genes Chromosomes Cancer 43 (4): 377-82, 2005.15852425
Uson PLS, Riegert-Johnson D, Boardman L, et al.: Germline Cancer Susceptibility Gene Testing in Unselected Patients With Colorectal Adenocarcinoma: A Multicenter Prospective Study. Clin Gastroenterol Hepatol 20 (3): e508-e528, 2022.33857637
Breen KE, Katona BW, Catchings A, et al.: An updated counseling framework for moderate-penetrance colorectal cancer susceptibility genes. Genet Med 24 (12): 2587-2590, 2022.36222830
Bychkovsky BL, Agaoglu NB, Horton C, et al.: Differences in Cancer Phenotypes Among Frequent CHEK2 Variants and Implications for Clinical Care-Checking CHEK2. JAMA Oncol 8 (11): 1598-1606, 2022.36136322
Mundt E, Mabey B, Rainville I, et al.: Breast and colorectal cancer risks among over 6,000 CHEK2 pathogenic variant carriers: A comparison of missense versus truncating variants. Cancer Genet 278-279: 84-90, 2023.37839337
Hazewinkel Y, López-Cerón M, East JE, et al.: Endoscopic features of sessile serrated adenomas: validation by international experts using high-resolution white-light endoscopy and narrow-band imaging. Gastrointest Endosc 77 (6): 916-24, 2013.23433877
Guarinos C, Juárez M, Egoavil C, et al.: Prevalence and characteristics of MUTYH-associated polyposis in patients with multiple adenomatous and serrated polyps. Clin Cancer Res 20 (5): 1158-68, 2014.24470512
Crockett SD, Snover DC, Ahnen DJ, et al.: Sessile serrated adenomas: an evidence-based guide to management. Clin Gastroenterol Hepatol 13 (1): 11-26.e1, 2015.24216467
Boparai KS, Mathus-Vliegen EM, Koornstra JJ, et al.: Increased colorectal cancer risk during follow-up in patients with hyperplastic polyposis syndrome: a multicentre cohort study. Gut 59 (8): 1094-100, 2010.19710031
Clendenning M, Young JP, Walsh MD, et al.: Germline Mutations in the Polyposis-Associated Genes BMPR1A, SMAD4, PTEN, MUTYH and GREM1 Are Not Common in Individuals with Serrated Polyposis Syndrome. PLoS One 8 (6): e66705, 2013.23805267
Yan HHN, Lai JCW, Ho SL, et al.: RNF43 germline and somatic mutation in serrated neoplasia pathway and its association with BRAF mutation. Gut 66 (9): 1645-1656, 2017.27329244
Quintana I, Mejías-Luque R, Terradas M, et al.: Evidence suggests that germline RNF43 mutations are a rare cause of serrated polyposis. Gut 67 (12): 2230-2232, 2018.29330307
Taupin D, Lam W, Rangiah D, et al.: A deleterious RNF43 germline mutation in a severely affected serrated polyposis kindred. Hum Genome Var 2: 15013, 2015.27081527
Dekker E, Bleijenberg A, Balaguer F, et al.: Update on the World Health Organization Criteria for Diagnosis of Serrated Polyposis Syndrome. Gastroenterology 158 (6): 1520-1523, 2020.31982410
Leggett BA, Devereaux B, Biden K, et al.: Hyperplastic polyposis: association with colorectal cancer. Am J Surg Pathol 25 (2): 177-84, 2001.11176066
Rashid A, Houlihan PS, Booker S, et al.: Phenotypic and molecular characteristics of hyperplastic polyposis. Gastroenterology 119 (2): 323-32, 2000.10930367 20389968
Place RJ, Simmang CL: Hyperplastic-adenomatous polyposis syndrome. J Am Coll Surg 188 (5): 503-7, 1999.10235578
Hyman NH, Anderson P, Blasyk H: Hyperplastic polyposis and the risk of colorectal cancer. Dis Colon Rectum 47 (12): 2101-4, 2004.15657661
Koide N, Saito Y, Fujii T, et al.: A case of hyperplastic polyposis of the colon with adenocarcinomas in hyperplastic polyps after long-term follow-up. Endoscopy 34 (6): 499-502, 2002.12048637
Jeevaratnam P, Cottier DS, Browett PJ, et al.: Familial giant hyperplastic polyposis predisposing to colorectal cancer: a new hereditary bowel cancer syndrome. J Pathol 179 (1): 20-5, 1996.8691339 96296836
Bengoechea O, Martínez-Peñuela JM, Larrínaga B, et al.: Hyperplastic polyposis of the colorectum and adenocarcinoma in a 24-year-old man. Am J Surg Pathol 11 (4): 323-7, 1987.3565675
McCann BG: A case of metaplastic polyposis of the colon associated with focal adenomatous change and metachronous adenocarcinomas. Histopathology 13 (6): 700-2, 1988.2466756
Muller C, Yamada A, Ikegami S, et al.: Risk of Colorectal Cancer in Serrated Polyposis Syndrome: A Systematic Review and Meta-analysis. Clin Gastroenterol Hepatol 20 (3): 622-630.e7, 2022.34089849
Kanth P, Yu Z, Keener MB, et al.: Cancer Risk in Patients With and Relatives of Serrated Polyposis Syndrome and Sporadic Sessile Serrated Lesions. Am J Gastroenterol 117 (2): 336-342, 2022.34889311
Biller LH, Ukaegbu C, Dhingra TG, et al.: A Multi-Institutional Cohort of Therapy-Associated Polyposis in Childhood and Young Adulthood Cancer Survivors. Cancer Prev Res (Phila) 13 (3): 291-298, 2020.32051178
Anthony E, Reece JC, Milanzi E, et al.: Body Mass Index, sex, non-steroidal anti-inflammatory drug medications, smoking and alcohol are differentially associated with World Health Organisation criteria and colorectal cancer risk in people with Serrated Polyposis Syndrome: an Australian case-control study. BMC Gastroenterol 22 (1): 489, 2022.36435745
Hurlstone DP, Cross SS, Slater R, et al.: Detecting diminutive colorectal lesions at colonoscopy: a randomised controlled trial of pan-colonic versus targeted chromoscopy. Gut 53 (3): 376-80, 2004.14960519
Saitoh Y, Waxman I, West AB, et al.: Prevalence and distinctive biologic features of flat colorectal adenomas in a North American population. Gastroenterology 120 (7): 1657-65, 2001.11375947
Hurlstone DP, Cross SS, Adam I, et al.: Endoscopic morphological anticipation of submucosal invasion in flat and depressed colorectal lesions: clinical implications and subtype analysis of the kudo type V pit pattern using high-magnification-chromoscopic colonoscopy. Colorectal Dis 6 (5): 369-75, 2004.15335372
Dacosta RS, Wilson BC, Marcon NE: New optical technologies for earlier endoscopic diagnosis of premalignant gastrointestinal lesions. J Gastroenterol Hepatol 17 (Suppl): S85-104, 2002.12000596
Rembacken BJ, Fujii T, Cairns A, et al.: Flat and depressed colonic neoplasms: a prospective study of 1000 colonoscopies in the UK. Lancet 355 (9211): 1211-4, 2000.10770302 20231071
Tsuda S, Veress B, Tóth E, et al.: Flat and depressed colorectal tumours in a southern Swedish population: a prospective chromoendoscopic and histopathological study. Gut 51 (4): 550-5, 2002.12235079
Rex DK, Helbig CC: High yields of small and flat adenomas with high-definition colonoscopes using either white light or narrow band imaging. Gastroenterology 133 (1): 42-7, 2007.17631129
Soetikno RM, Kaltenbach T, Rouse RV, et al.: Prevalence of nonpolypoid (flat and depressed) colorectal neoplasms in asymptomatic and symptomatic adults. JAMA 299 (9): 1027-35, 2008.18319413
Stoffel EM, Turgeon DK, Stockwell DH, et al.: Chromoendoscopy detects more adenomas than colonoscopy using intensive inspection without dye spraying. Cancer Prev Res (Phila) 1 (7): 507-13, 2008.19139000
Le Rhun M, Coron E, Parlier D, et al.: High resolution colonoscopy with chromoscopy versus standard colonoscopy for the detection of colonic neoplasia: a randomized study. Clin Gastroenterol Hepatol 4 (3): 349-54, 2006.16527699
Brooker JC, Saunders BP, Shah SG, et al.: Total colonic dye-spray increases the detection of diminutive adenomas during routine colonoscopy: a randomized controlled trial. Gastrointest Endosc 56 (3): 333-8, 2002.12196768
Stoffel EM, Turgeon DK, Stockwell DH, et al.: Missed adenomas during colonoscopic surveillance in individuals with Lynch Syndrome (hereditary nonpolyposis colorectal cancer). Cancer Prev Res (Phila) 1 (6): 470-5, 2008.19138994
Hüneburg R, Lammert F, Rabe C, et al.: Chromocolonoscopy detects more adenomas than white light colonoscopy or narrow band imaging colonoscopy in hereditary nonpolyposis colorectal cancer screening. Endoscopy 41 (4): 316-22, 2009.19340735
Wallace MH, Frayling IM, Clark SK, et al.: Attenuated adenomatous polyposis coli: the role of ascertainment bias through failure to dye-spray at colonoscopy. Dis Colon Rectum 42 (8): 1078-80, 1999.10458134
Dekker E, Boparai KS, Poley JW, et al.: High resolution endoscopy and the additional value of chromoendoscopy in the evaluation of duodenal adenomatosis in patients with familial adenomatous polyposis. Endoscopy 41 (8): 666-9, 2009.19670132
Sakamoto H, Yamamoto H, Hayashi Y, et al.: Nonsurgical management of small-bowel polyps in Peutz-Jeghers syndrome with extensive polypectomy by using double-balloon endoscopy. Gastrointest Endosc 74 (2): 328-33, 2011.21704992

## Psychosocial Issues in Hereditary Colon Cancer Syndromes

### Introduction

Psychosocial research in cancer genetic counseling and testing focuses on the interest in testing among populations at varying levels of disease risk, psychological outcomes, interpersonal and familial effects, and cultural and community reactions. This research also identifies behavioral factors that encourage or impede surveillance and other health behaviors. Data resulting from psychosocial research can guide clinician interactions with patients and may include the following:

- Decision-making about risk-reduction interventions, risk assessment, and genetic testing.
- Evaluation of psychosocial interventions to reduce distress and/or other negative sequelae related to risk notification of genetic testing.
- Resolution of ethical concerns.

This section of the summary will focus on psychosocial aspects of genetic counseling and testing for Lynch syndrome, familial adenomatous polyposis (FAP), and Peutz-Jeghers syndrome (PJS), including issues surrounding medical screening, risk-reducing surgery, and chemoprevention for these syndromes.

### Psychosocial Issues in Lynch Syndrome

#### Participation in genetic counseling and testing for Lynch syndrome

##### Early research on genetic counseling/testing uptake

Early studies that evaluated the uptake of genetic counseling and testing focused on selected, high-risk research populations, including colorectal cancer (CRC) patients and unaffected family members identified at high risk of CRC largely based on family history. The participants were recruited mainly from clinical settings and familial colon cancer registries. Most studies recruited index cancer cases, typically CRCs, specifically to offer genetic counseling and germline testing for mismatch repair (MMR) variants; these were frequently offered as free services.[1-9] Counseling and testing were similarly offered to relatives of index cases with pathogenic variants. A review that summarized these early studies reported a wide range of testing uptake rates, from 14% to 75%, and included uptake among both index cases and at-risk relatives who were offered testing.[10] The review indicated that the primary reasons for undergoing genetic testing included a desire to learn about children’s risk and to learn about early detection and screening needs, as well as a reduction in uncertainty. Reasons for declining testing included cost, insurance discrimination concerns, potential adverse emotional effects for oneself or one’s family, low anticipated benefit, and lack of time.

##### Uptake of genetic counseling and germline testing following universal tumor screening for microsatellite instability (MSI) and/or immunohistochemistry (IHC)

While these early studies of genetic testing uptake offered preliminary insight regarding why individuals may or may not be motivated to have testing, the process for offering genetic counseling and testing differed from what has evolved into current clinical practice. Clinical practice relies less solely on family history to identify individuals who may benefit from testing, and instead utilizes universal molecular diagnostic testing of CRC and endometrial cancer tumors in newly diagnosed patients using MSI and/or IHC as an initial screen for Lynch syndrome. (Refer to the Universal tumor testing to screen for Lynch syndrome section of this summary for more information.)

While universal MSI/IHC screening is increasingly being adopted to identify newly diagnosed patients who may have a germline variant, an important implication is that not all individuals who may be appropriate for germline testing follow through with recommended genetic counseling and testing services. Two reports from a single institution found that 20% and 13% of CRC and endometrial cancer index cases, respectively, with abnormal IHC results followed through with germline variant testing for Lynch syndrome.[11,12] These studies did not solicit reasons for follow through with genetic counseling and testing. However, it has been suggested that higher levels of patient completion of genetic testing after abnormal MSI/IHC results may be associated with having genetic counselors involved in this process to disclose screen-positive results, provide counseling after MSI/IHC testing, or facilitate referrals.[13]

In a study of 145 patients with CRC in the Kaiser Permanente Northwest health care system who were surveyed before receiving their MSI results, most patients had a positive attitude toward MSI/IHC screening.[14] The majority (84.8%) endorsed six or more benefits of MSI/IHC screening; however, 89.4% also endorsed fewer than four potential barriers, primarily the cost of additional testing and surveillance. Patients with stronger family histories of cancer were more likely to cite fewer barriers of MSI/IHC screening. Patients also experienced minimal distress associated with the screening, with 77.2% of participants having a score of zero (indicating no distress).

Education regarding family history and cancer risk and encouragement to have testing from health care providers may facilitate uptake of genetic counseling and testing. A small (n = 19) qualitative study of newly diagnosed patients with CRC who met high-risk criteria for referral to cancer genetics risk assessment and counseling identified potential reasons why patients may not seek counseling as recommended. These reasons included incomplete knowledge of family cancer history and not realizing the relevance of family history to their personal cancer diagnosis; lack of a specific, direct physician’s recommendation for counseling; and viewing counseling as a lower priority than coping with the immediate demands of a new cancer diagnosis.[15] In a follow-up survey of 91 individuals in a randomized trial to promote colonoscopy screening in those at risk for Lynch syndrome, only 24% reported ever having discussed genetic testing with their physicians, and the most common barrier to undergoing testing was lack of advice to do so by a health care provider.[16]

##### Uptake of cascade screening by at-risk relatives

There is increasing adoption of universal screening of newly diagnosed tumors for Lynch syndrome in clinical practice. However, the clinical benefit and cost-effectiveness of this process have been attributed to uptake of cascade screening, or predictive testing among at-risk relatives of index cancer cases who are found to have a pathogenic germline variant. A systematic review evaluated the frequency and predictors of genetic testing uptake by first-degree relatives (FDRs) of index cases with Lynch syndrome.[17] Among four studies that were included in the review and reported uptake rates among FDRs, results showed that 34% to 52% of FDRs had undergone testing. Factors associated with testing uptake in relatives included age (<50 y), female sex, parenthood, employment status, level of education, participation in medical research, psychological factors (lack of depressive symptoms), and the number of relatives affected with cancer.

A large retrospective study of genetic testing uptake across three generations of Finnish families enrolled in a Lynch syndrome registry also found an incomplete uptake of predictive testing among at-risk relatives of individuals with pathogenic variants, and a decreasing uptake rate by generation.[18] Among 1,184 probands with a Lynch syndrome variant, 67%, 43%, and 24% of at-risk adult first-, second-, and third-generation relatives, respectively, had predictive testing. Among 539 first-generation Lynch syndrome variant carriers, 62% of their at-risk adult children underwent testing. In multivariate analysis, older age, family-specific variant (MLH1 and MSH2 vs. MSH6), being an only child or having a sibling with a pathogenic variant, and having a parent who adhered to colonoscopy surveillance were associated with predictive testing uptake. This study suggested that family-level factors such as predictive testing and screening behavior may influence predictive testing among at-risk relatives of individuals with Lynch syndrome–associated variants.

Published reports of interventions to increase uptake of cascade screening in Lynch syndrome families are limited. An Australian paper compared two approaches for informing at-risk relatives about pathogenic variants for hereditary cancers, including Lynch syndrome.[19] In this study, index cases from 33 kindreds who had undergone genetic testing provided consent for their clinicians to send detailed letters to at-risk relatives advising them about the identification of an inherited cancer predisposition in the family. Letters also included a recommendation to discuss the information with a physician or genetics specialist, and they provided information about what a genetics evaluation comprised. Within the first 2 years of follow-up, 40% of first- and second-degree relatives (SDRs) had predictive genetic testing, were determined to be presumed noncarriers, or had undergone evaluation but declined genetic testing. The authors compared these findings with a cohort of 41 kindreds seen prior to the initiation of the clinician-generated letters, of whom variant-positive index cases had only been asked to advise relatives that genetic testing was available. In the earlier cohort, 23% of at-risk relatives had sought services to clarify their genetic risk status, which was significantly fewer compared with the group receiving clinician-generated letters (P = .001). Receipt of the letters did not generate concerns about a breach of privacy or autonomy.

Refer to the Ethical, Legal, and Social Implications section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for information about ethical concerns, including duty to warn.

#### Psychological impact of participating in genetic counseling and testing for Lynch syndrome

Studies have examined the psychological status of individuals before, during, and after genetic counseling and testing for Lynch syndrome. Some studies have included only persons with no personal history of any Lynch syndrome–associated cancers,[20-23] and others have included both CRC patients and cancer-unaffected persons who are at risk of having a Lynch syndrome pathogenic variant.[24-28] Cross-sectional evaluations of the psychosocial characteristics of individuals undergoing Lynch syndrome genetic counseling and testing have indicated that mean pretest scores of psychological functioning for most participants are within normal limits,[24-26] although one study comparing affected and unaffected individuals showed that affected individuals had greater distress and worry associated with Lynch syndrome.[29]

Several longitudinal studies have evaluated psychological outcomes before genetic counseling and testing for Lynch syndrome and at multiple time periods in the year after disclosure of test results. One study examined changes in anxiety based on personal cancer history, gender, and age (younger than 50 y vs. older than 50 y) before and 2 weeks after a pretest genetic-counseling session. Affected and unaffected female participants in both age groups and affected men older than 50 years showed significant decreases in anxiety over time. Unaffected men younger than 50 years maintained low levels of anxiety; however, affected men younger than 50 years showed no reductions in the anxiety levels reported at the time of pretest counseling.[30] A study that evaluated psychological distress 8 weeks postcounseling (before disclosure of test results) among both affected and unaffected individuals found a significant reduction in general anxiety, cancer worry, and distress.[29] In general, findings from studies within the time period immediately after disclosure of pathogenic variant status (e.g., 2 weeks to 1 month) suggested that carriers of mismatch repair (MMR) pathogenic variants may experience increased general distress,[22,27] cancer-specific distress,[20,21] or cancer worries [27] relative to their pretest measurements. Carriers often experienced significantly higher distress after disclosure of test results than do individuals who do not carry a pathogenic variant previously identified in the family (noncarrier).[20-22,27] However, in most cases, carriers’ distress levels subsided during the course of the year after disclosure [22,27] and did not differ from pretest distress levels at 1 year postdisclosure.[20,21] Findings from these studies also indicated that noncarriers experienced a reduction or no change in distress up to 1 year after results disclosure.[20-22,27] A study that included unaffected individuals and CRC patients found that distress levels among patients did not differ between carriers and individuals who received results that were uninformative or showed a variant of unknown significance at any point up to 1 year posttest and were similar compared with pretest distress levels.[28]

A limited number of studies have examined longer-term psychosocial outcomes after Lynch syndrome genetic counseling and testing.[20,31,32] Longitudinal studies that evaluated psychological distress before and after genetic testing found that long-term distress levels (measured at 3 or 7 years posttesting) among carriers and noncarriers of pathogenic variants were similar to distress levels at baseline.[20,32] with one exception: noncarriers’ cancer-specific distress scores in one study [20] showed a sustained decrease posttesting and were significantly lower than their baseline scores and with carriers’ scores at 1 year posttesting, with a similar trend observed at 3 years posttesting. In one study, carriers were more likely to be worried about CRC risk at 7 years posttesting; however, noncarriers who reported worry about CRC (i.e., “worried to some extent” or “very worried”) were more likely to doubt the validity of their test result than were noncarriers who reported no worry.[32] When asked about their satisfaction with the decision to have testing, the majority of carriers and noncarriers were extremely satisfied up to 7 years posttesting and indicated they would be willing to undergo testing again.[32]

Findings from some studies suggested that there may be subgroups of individuals at higher risk of psychological distress after disclosure of test results, including those who present with relatively higher scores on measures of general or cancer-specific distress before undergoing testing.[24-28,33] A study of CRC patients who had donated blood for Lynch syndrome testing found that higher levels of depressive symptoms and/or anxiety were found among women, younger individuals, non-White individuals, and those with less formal education and fewer and less satisfactory sources of social support.[24] A subgroup of individuals who showed higher levels of psychological distress and lower quality of life and social support were identified from the same population; in addition, this subgroup was more likely to worry about finding out that they were carriers of Lynch syndrome pathogenic variants and being able to cope with learning their test results.[25] In a follow-up report that evaluated psychological outcomes after the disclosure of test results among CRC patients and relatives at risk of having a Lynch syndrome pathogenic variant, a subgroup with the same psychosocial characteristics experienced higher levels of general distress and distress specific to the experience of having genetic testing within the year after disclosure, regardless of variant status. Non-White individuals and those with lower education had higher levels of depression and anxiety scores at all times compared with White individuals and those with higher education, respectively.[27] Other studies have also found that a prior history of major or minor depression, higher pretest levels of cancer-specific distress, having a greater number of cancer-affected FDRs, greater grief reactions, and greater emotional illness–related representations predicted higher levels of distress from 1 to 6 months after disclosure of test results.[28,33] While further research is needed in this area, case studies indicate that it is important to identify individuals who may be at risk of experiencing psychiatric distress and to provide psychological support and follow-up throughout the genetic counseling and genetic testing process.[34]

Studies also have examined the effect of Lynch syndrome genetic counseling and testing on cancer risk comprehension. One study reported that nearly all carriers and noncarriers of pathogenic variants could accurately recall the test result 1 year after disclosure. More noncarriers than carriers correctly identified their risk of developing CRC at both 1 month and 1 year after result disclosure. Carriers of pathogenic variants who incorrectly identified their CRC risk were more likely to have had lower levels of pretest subjective risk perception compared with those who correctly identified their level of risk.[22] Another study reported that accuracy of estimating colorectal and endometrial cancer risk improved after disclosure of variant status in carriers and noncarriers.[23]

#### Psychosocial aspects of screening and risk reduction interventions for Lynch syndrome

##### Screening

###### Colorectal screening for Lynch syndrome

Benefits of genetic counseling and testing for Lynch syndrome include the opportunity for individuals to learn about options for the early detection and prevention of cancer, including screening and risk-reducing surgery. Studies suggest that many individuals at risk of Lynch syndrome may have had some CRC screening before genetic counseling and testing, but most are not likely to adhere to Lynch syndrome screening recommendations. Among individuals aged 18 years or older who did not have a personal history of CRC and who participated in U.S.-based research protocols offering genetic counseling and testing for Lynch syndrome, between 52% and 62% reported ever having had a colonoscopy before genetic testing.[1,3,35,36] Among cancer-unaffected individuals who participated in similar research in Belgium and Australia, 51% and 68%, respectively, had ever had a colonoscopy before study entry.[23 ,37] Factors associated with ever having a colonoscopy before genetic testing included higher income and older age,[35] higher perceived risk of developing CRC,[37] higher education level, and being informed of increased risk of CRC.[36]

In a study of cancer-affected and cancer-unaffected individuals who fulfilled clinical criteria for Lynch syndrome, 92% reported having had a colonoscopy and/or flexible sigmoidoscopy at least once before genetic testing.[38] Another study of unaffected individuals presenting for genetic risk assessment and possible consideration of Lynch syndrome, FAP, or APC I1307K genetic testing reported that 77% had undergone at least one screening exam (either colonoscopy, flexible sigmoidoscopy, or barium enema).

Three studies determined whether cancer-unaffected individuals adhered to Lynch syndrome colonoscopy screening recommendations before genetic testing, and reported adherence rates of 10%,[23] 28%,[36] and 47%.[38]

Several longitudinal studies examined the use of screening colonoscopy by cancer-unaffected individuals after undergoing testing for a known Lynch syndrome pathogenic variant.[23,35-37] These studies compared colonoscopy use before Lynch syndrome genetic testing with colonoscopy use within 1 year after disclosure of test results. One study reported that carriers of Lynch syndrome pathogenic variants were more likely to have a colonoscopy than were noncarriers and those who declined testing (73% vs. 16% vs. 22%) and that colonoscopy use increased among carriers (36% vs. 73%) in the year after disclosure of results.[36] Two other studies reported that carriers’ colonoscopy rates at 1 year after disclosure of results (71% and 53%) were not significantly different from rates before testing,[35,37] although noncarriers’ colonoscopy rates decreased in the same time period. Factors associated with colonoscopy use at 1 year after disclosure of results included carrying a Lynch syndrome–predisposing pathogenic variant,[35-37] older age,[35] and greater perceived control over CRC. These findings suggest that colonoscopy rates increase or are maintained among carriers of pathogenic variants within the year after disclosure of results and that rates decrease among noncarriers. Data from a longitudinal study including 134 carriers of MMR pathogenic variants with and without a prior Lynch syndrome–related cancer diagnosis found that those who did not undergo colonoscopy for surveillance within 6 months after receiving genetic test results were six times more likely to report clinically significant depressive symptoms as measured by the Center for Epidemiological Studies-Depression (CES-D) scale (odds ratio [OR], 6.06; 95% confidence interval [CI], 2.09–17.59). Higher levels of CRC worry measured before genetic testing also were associated with clinically significant depressive symptoms (OR, 1.53; 95% CI, 1.19–1.97).[39]

Two studies examined the level of adherence to published screening guidelines after Lynch syndrome genetic testing, based on variant status. One study reported a colonoscopy adherence rate of 100% among carriers of pathogenic variants.[23] Another study found that 35% of carriers and 13% of noncarriers did not adhere to published guidelines for appropriate CRC screening;[35] in both groups, about one-half screened more frequently than published guidelines recommend, and one-half screened less frequently.

The longitudinal studies described above examined colorectal screening behavior within a relatively short period of time (1 year) after receiving genetic test results, and less is known about longer-term use of screening behaviors. A longitudinal study (N = 73) that examined psychological and behavioral outcomes among cancer-unaffected individuals at 3 years after disclosure of genetic test results found that all carriers (n = 19) had undergone at least one colonoscopy between 1 and 3 years postdisclosure.[20] A longitudinal study of similar outcomes up to 7 years posttesting also found that all carriers had undergone colonoscopy; most (83%) underwent the procedure every 3 years or more frequently as recommended, and 11% reported longer screening intervals.[32] In this study, those who reported longer screening intervals than recommended also were more likely to report a fear of dying soon. Also, 16% of noncarriers reported undergoing colonoscopy within the 7 years posttesting; those who indicated doubts about the validity of their test result were more likely to have had a colonoscopy.[32] Ninety-four percent of carriers in one study stated an intention to have annual or biannual colonoscopy in the future; among noncarriers, 64% did not intend to have colonoscopy in the future or were unsure, and 33% intended to have colonoscopy at 5- to 6-year intervals or less frequently.[23] A cross-sectional study conducted in the Netherlands examined the use of flexible sigmoidoscopy or colonoscopy among individuals with CRC, endometrial cancer, or a clinical or genetic diagnosis of Lynch syndrome during a time that ranged from 2 years to 18 years after risk assessment and counseling.[40] Eighty-six percent of carriers of Lynch syndrome pathogenic variants, 68% of those who did not test or who had an uninformative Lynch syndrome genetic test result, and 73% of those with a clinical Lynch syndrome diagnosis were considered adherent with screening recommendations, based on data obtained from medical records. Participants also answered questions regarding screening adherence, and 16% of the overall sample reported that they had undergone screening less frequently than recommended. For the overall sample, greater perceived barriers to screening were associated with screening nonadherence as determined through medical record review, and embarrassment with screening procedures was associated with self-reported nonadherence. A second cross-sectional study, also conducted in the Netherlands, surveyed cancer-unaffected carriers of Lynch syndrome variants (n = 42) regarding their colorectal screening behaviors after learning their pathogenic variant status (range, 6 mo–8.5 y). Thirty-one percent of respondents reported that they had undergone annual colonoscopy before Lynch syndrome genetic testing, and 88% reported that they had undergone colonoscopy since their genetic diagnosis (P < .001).[31]

Less is known about Lynch syndrome screening behaviors in individuals who may be at risk of having a germline pathogenic variant but who do not undergo genetic counseling and/or genetic testing to learn about their risk statuses. Among relatives of carriers of a Lynch syndrome germline pathogenic variant from the Australian Colorectal Cancer Family Registry, 26 who had not undergone genetic counseling and/or testing completed an interview to assess their perceived risk of developing CRC in the next 10 years and to self-report their colonoscopy status.[41] Their mean perceived risk was 30.5%, which exceeded the mean predicted risk of 4%, as calculated by MMRpro software.[42] Seventy-three percent (n = 19) reported undergoing a colonoscopy (one for diagnostic reasons); 35% had undergone colonoscopy within the past 2 years and had adhered to CRC screening recommendations. Perceived risk was slightly and positively correlated with years since an individual's last colonoscopy (Pearson's r, 0.49; range, 0.02–0.79) but otherwise was not associated with other screening or personal characteristics. The authors concluded that perceived CRC risk alone may not be a sufficient predictor of colonoscopy use in relatives of Lynch syndrome pathogenic variant carriers who have not undergone genetic counseling and/or testing.[41] Another study compared colonoscopy screening rates and predictors of CRC screening participation in two different populations: (1) people diagnosed with Lynch syndrome (n = 59), and (2) people at risk for Lynch syndrome who did not have genetic testing (n = 47). Individuals without genetic testing had lower colonoscopy participation rates than those with a Lynch syndrome pathogenic variant (47% vs. 73%, respectively). Perceived CRC risk and physician recommendation for CRC screening were important predictors of colonoscopy screening adherence, independent of an individual's genetic testing status.[43]

###### Gynecologic cancer screening for Lynch syndrome

Several small studies have examined the use of screening for endometrial and ovarian cancers associated with Lynch syndrome (refer to Table 16). There are several limitations to these studies, including small sample sizes, short follow-up, retrospective design, reliance on self-report as the data source, and some not including patients who had undergone Lynch syndrome genetic testing. Several studies have included individuals in the screening uptake analysis who do not meet the minimum age criteria for undergoing screening. Of the studies that assessed screening use after a negative test result for a known pathogenic variant in the family, only a few assessed indications for that screening, such as follow-up of a previously identified abnormality. Last, some studies have included patients in the uptake analysis who were actively undergoing treatment for another cancer, which could influence provider screening recommendations. Therefore, Table 16 is limited to studies with patients who had undergone Lynch syndrome genetic testing, larger sample sizes, longer follow-up, and analysis that included individuals of an appropriate screening age.

Table 16. Uptake of Gynecologic Screening Among Women Who Have Undergone Lynch Syndrome Genetic Testing

Study Citation | Study Population | Uptake of Gynecologic Screening Before Genetic Counseling and Testing | Uptake of Gynecologic Screening After Receipt of Genetic Test Results | Length of Follow-up | Comments
Claes et al. (2005)^1,a ^ [23] | Carriers (n = 7) | Not reported | TVUS | 1 y | One noncarrier reported undergoing TVUS for a previous endometrial problem, while three noncarriers reported undergoing the procedure for preventive reasons
Claes et al. (2005)^1,a ^ [23] | Carriers (n = 7) | Not reported | – Carriers 86% (6/7) | 1 y | One noncarrier reported undergoing TVUS for a previous endometrial problem, while three noncarriers reported undergoing the procedure for preventive reasons
Claes et al. (2005)^1,a ^ [23] | Noncarriers (n = 16) | Not reported | – Carriers 86% (6/7) | 1 y | One noncarrier reported undergoing TVUS for a previous endometrial problem, while three noncarriers reported undergoing the procedure for preventive reasons
Claes et al. (2005)^1,a ^ [23] | Noncarriers (n = 16) | Not reported | – Noncarriers 27% (4/15) | 1 y | One noncarrier reported undergoing TVUS for a previous endometrial problem, while three noncarriers reported undergoing the procedure for preventive reasons
Collins et al. (2007)^1,a ^ [20] | Carriers (n = 13) | Not reported | TVUS | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Collins et al. (2007)^1,a ^ [20] | Carriers (n = 13) | Not reported | – Carriers 69% (9/13) | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Collins et al. (2007)^1,a ^ [20] | Carriers (n = 13) | Not reported | – Noncarriers 6% (2/32) | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Collins et al. (2007)^1,a ^ [20] | Noncarriers (n = 32) | Not reported | ES | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Collins et al. (2007)^1,a ^ [20] | Noncarriers (n = 32) | Not reported | – Carriers 54% (7/13) | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Collins et al. (2007)^1,a ^ [20] | Noncarriers (n = 32) | Not reported | – Noncarriers 3% (1/32) | 3 y | Two of four carriers had an RRH/RRSO by the 3-year follow-up assessment
Yurgelun et al. (2012): Cohort 1^2,a ^ [44] | 77 at risk of Lynch syndrome–associated EC; 45 carriers; 19 no genetic testing but Lynch syndrome–associated family history | 75% (58/77) engaged in EC screening or EC risk-reduction intervention; 42 underwent annual TVUS and/or ES; 16 underwent RRH | Not reported | N/A
Yurgelun et al. (2012): Cohort 2^1,a^ [44] | 40 women at clinical risk of Lynch syndrome | 65% (26/40) adhered to EC screening or risk reduction; 6 underwent RRH; 13 underwent annual ES and/or TVUS; 6 had not reached recommended screening age | Carriers: 100% (n = 16) adhered to EC screening or risk-reducing strategies; 4 underwent pretest RRH; 5 underwent RRH; 5 underwent EC screening (TVUS and/or ES); 2 had not reached recommended screening age | 1 y
Yurgelun et al. (2012): Cohort 2^1,a^ [44] | Carriers (n = 16) | 65% (26/40) adhered to EC screening or risk reduction; 6 underwent RRH; 13 underwent annual ES and/or TVUS; 6 had not reached recommended screening age | | 1 y
Yurgelun et al. (2012): Cohort 2^1,a^ [44] | Noncarriers (n = 9); 14 indeterminate results; 1 variant of uncertain significance | 65% (26/40) adhered to EC screening or risk reduction; 6 underwent RRH; 13 underwent annual ES and/or TVUS; 6 had not reached recommended screening age | Noncarriers: 11% (1/9) underwent EC screening; 11% (1/9) underwent RRH | 1 y

EC = endometrial cancer; ES = endometrial sampling; RRH = risk-reducing total abdominal hysterectomy; RRSO = risk-reducing salpingo-oophorectomy; TVUS = transvaginal ultrasound.

Noncarrier(s) = negative for known pathogenic variant in family.

^1^Prospective study design.

^2^Retrospective study design.

^a^Self-report as data source.

Overall, these studies have included relatively small numbers of women and suggest that screening rates for Lynch syndrome–associated gynecologic cancers are low before genetic counseling and testing. However, after participation in genetic education and counseling and the receipt of Lynch syndrome pathogenic variant test results, uptake of gynecologic cancer screening in carriers generally increases, while noncarriers decrease use.

##### Risk-reducing surgery

There is no consensus regarding the use of risk-reducing colectomy for Lynch syndrome, and little is known about decision-making and psychological sequelae surrounding risk-reducing colectomy for Lynch syndrome.

Among individuals who received positive test results, a greater proportion indicated interest in having risk-reducing colectomy after disclosure of results than at baseline.[3] This study also indicated that consideration of risk-reducing surgery for Lynch syndrome may motivate participation in genetic testing. Before receiving results, 46% indicated that they were considering risk-reducing colectomy, and 69% of women were considering risk-reducing total abdominal hysterectomy (RRH) and risk reducing bilateral salpingo-oophorectomy (RRSO); however, this study did not assess whether individuals actually followed through with risk-reducing surgery after they received their test results. Before undergoing Lynch syndrome genetic counseling and testing, 5% of cancer-unaffected individuals at risk of an MMR variant in a longitudinal study reported that they would consider colectomy, and 5% of women indicated that they would have an RRH and an RRSO, if they were found to be pathogenic variant–positive. At 3 years after disclosure of results, no participants had undergone risk-reducing colectomy.[20,37] Two women who had undergone an RRH before genetic testing underwent RRSO within 1 year after testing,[37] however, no other female carriers of pathogenic variants in the study reported having either procedure at 3 years after test result disclosure.[20]

In a cross-sectional quality-of-life and functional outcome survey of Lynch syndrome patients with more extensive (subtotal colectomy) or less extensive (segmental resection or hemicolectomy) resections, global quality-of-life outcomes were comparable, although patients with greater extent of resection described more frequent bowel movements and related dysfunction.[45]

##### Family communication

Family communication about genetic testing for hereditary CRC susceptibility, and specifically about the results of such testing, is complex. It is generally accepted that communication about genetic risk information within families is largely the responsibility of family members themselves. A few studies have examined communication patterns in families who had been offered Lynch syndrome genetic counseling and testing. Studies have focused on whether individuals disclosed information about Lynch syndrome genetic testing to their family members, to whom they disclosed this information, and family-based characteristics or issues that might facilitate or inhibit such communication. These studies examined communication and disclosure processes in families after notification by health care professionals about a Lynch syndrome predisposition and have comprised relatively small samples.

Research findings indicate that individuals are generally willing to share information about the presence of a Lynch syndrome pathogenic variant within their families.[46-49] Motivations for sharing genetic risk information include a desire to increase family awareness about personal risk, health promotion options and predictive genetic testing, a desire for emotional support, and a perceived moral obligation and responsibility to help others in the family.[47-49] Findings across studies suggest that most study participants believed that Lynch syndrome genetic risk information is shared openly within families; however, such communication is more likely to occur with FDRs (e.g., siblings, children) than with more distant relatives.[46-49]

One Finnish study recruited parents aged 40 years or older and known to carry an MMR pathogenic variant to complete a questionnaire that investigated how parents shared knowledge of genetic risk with their adult and minor offspring. The study also identified challenges in the communication process.[50] Of 248 parents, 87% reported that they had disclosed results to their children. Reasons for nondisclosure were consistent with previous studies (young age of offspring, socially distant relationships, or feelings of difficulty in discussing the topic).[47,48,51] Nearly all parents had informed their adult offspring about their genetic risk and the possibility of genetic testing, but nearly one-third were unsure of how their offspring had used the information. Parents identified discussing their children’s cancer risk as the most difficult aspect of the communication process. Of the 191 firstborn children informed, 69% had undergone genetic testing. One-third of the parents suggested that health professionals should be involved in disclosure of the information and that a family appointment at the genetics clinic should be made at the time of disclosure.

In regard to informing second- and third-degree relatives, individuals may favor a cascade approach; for example, it is assumed that once a relative is given information about the family’s risk of Lynch syndrome, he or she would then be responsible for informing his or her FDRs.[46-48] This cascade approach to communication is distinctly preferred in regard to informing relatives’ offspring, particularly those of minor age, and the consensus suggests that it would be inappropriate to disclose such information to an SDR or third-degree relative without first proceeding through the family relational hierarchy.[46-48,51] In one study, individuals who had undergone testing and were found to carry a Lynch syndrome–predisposing pathogenic variant were more likely to inform at least one SDR or third-degree relative about their genetic test results than individuals who had received true negative or uninformative results.[49]

While communication about genetic risk is generally viewed as an open process, some communication barriers were reported across studies. Reasons for not informing a relative included lack of a close relationship and lack of contact with the individual; in fact, emotional, rather than relational, closeness seemed to be a more important determinant of the degree of risk communication. A desire to not worry relatives with information about test results and the perception that relatives would not understand the meaning of this information also have been cited as communication barriers.[49] Disclosure seemed less likely if at-risk individuals were considered too young to receive the information (i.e., children), if information about the hereditary cancer risk had previously created conflict in the family,[48] or if it was assumed that relatives would be uninterested in information about testing.[47] Prior existence of conflict seemed to inhibit discussions about hereditary cancer risk, particularly if such discussions involved disclosure of bad news.[48]

For most participants in these studies, the news that the pattern of cancers in their families was attributable to a Lynch syndrome–predisposing pathogenic variant did not come as a surprise,[46,47] as individuals had suspected a hereditary cause for the familial cancers or had prior family discussions about cancer. Identification of a Lynch syndrome–predisposing pathogenic variant in the family was considered a private matter but not necessarily a secret,[46] and many individuals had discussed the family’s pathogenic variant status with someone outside of the family. Knowledge about the detection of a Lynch syndrome–predisposing pathogenic variant in the family was not viewed as stigmatizing, though individuals expressed concern about the potential impact of this information on insurance discrimination.[46] Also, while there may be a willingness to disclose information about the presence of a pathogenic variant in the family, one study suggests a tendency to remain more private about the disclosure of individual results, distinguishing personal results from familial risk information.[51] In a few cases, individuals reported that their relatives expressed anger, shock, or other negative emotional reactions after receiving news about the family’s Lynch syndrome risk;[48] however, most indicated little to no difficulty in informing their relatives.[47] It was suggested that families who are more comfortable and open with cancer-related discussions may be more receptive and accepting of news about genetic risk.[48]

In some cases, probands reported feeling particularly obliged to inform family members about a hereditary cancer risk [48] and were often the strongest advocates for encouraging their family members to undergo genetic counseling and testing for the family pathogenic variant.[46] Some gender and family role differences also emerged in regard to the dissemination of hereditary cancer risk information. One study reported that female probands were more comfortable discussing genetic information than were male probands and that male probands showed a greater need for professional support during the family communication process.[47] Another study suggested that mothers may be particularly influential members of the family network in regard to communicating health risk information.[52] Pathogenic variant–negative individuals, individuals who chose not to be tested, and spouses of at-risk persons reported not feeling as personally involved with the risk communication process compared with probands and other at-risk persons who had undergone genetic testing.[46]

Various modes of communication (e.g., in-person, telephone, or written contact) may typically be used to disclose genetic risk information within families.[46 -48] In one study, communication aids such as a genetic counseling summary letter or Lynch syndrome booklet were viewed as helpful adjuncts to the communication process but were not considered central or necessary to its success.[47] Studies have suggested that recommendations by health care providers to inform relatives about hereditary cancer risk may encourage communication about Lynch syndrome [48] and that support by health care professionals may be helpful in overcoming barriers to communicating such information to family members.[51]

Much of the literature to date on family communication has focused on disclosure of test results; however, other elements of family communication are currently being explored. One study evaluated the role of older family members in providing various types of support (e.g., instrumental, emotional, crisis help, and dependability when needed) among individuals with Lynch syndrome and their family members (206 respondents from 33 families).[7,53] Respondents completed interviews about their family social network (biological and non-biological relatives and others outside the family) and patterns of communication within their family. The median age of the respondents and the members of their family social network did not differ (age 43 y). The study found that 23% of the members of the family social network encouraged CRC screening (other types of support, such as social support, were reported much more frequently). Those who encouraged screening were older, female, and significant others or biological family members, rather than nonfamily members. Given that many of the members of the family social network did not live in the same household, the study points out the importance of extended family in the context of screening encouragement and support.

### Psychosocial Issues in Familial Adenomatous Polyposis (FAP)

#### Participation in genetic counseling and testing for FAP

The uptake for genetic testing for FAP may be higher than testing for Lynch syndrome. A study of asymptomatic individuals in the United States at risk of FAP who were enrolled in a CRC registry and were offered genetic counseling found that 82% of adults and 95% of minors underwent genetic testing.[54] Uptake rates close to 100% have been reported in the United Kingdom.[55] A possible explanation for the greater uptake of APC genetic testing is that it may be more cost-effective than annual endoscopic screening [56] and can eliminate the burden of annual screening, which must often be initiated before puberty. The opportunity to eliminate worry about potential risk-reducing surgery is another possible benefit of genetic testing for FAP. The decision to have APC genetic testing may be viewed as a medical management decision;[57] the potential psychosocial factors that may influence the testing decision are not as well studied for FAP as for other hereditary cancer syndromes. The higher penetrance of APC pathogenic variants, earlier onset of disease, and the unambiguous phenotype also may influence the decision to undergo genetic testing for this condition, possibly because of a greater awareness of the disease and more experience with multiple family members being affected.

Genetic testing for FAP is presently offered to children with affected parents, often at the age of 10 to 12 years, when endoscopic screening is recommended. Because it is optimal to diagnose FAP before age 18 years to prevent CRC and because screening and possibly surgery are warranted at the time an individual is identified as a carrier of an APC pathogenic variant, genetic testing of minors is justified in this instance. (Refer to the Testing in children section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for a more detailed discussion regarding the ethical, psychosocial, and genetic counseling issues related to genetic testing in children.)

In a survey conducted in the Netherlands of members of families with FAP, one-third (34%) believed that it was most suitable to offer APC gene testing to children before age 12 years, whereas 38% preferred to offer testing to children between the ages of 12 and 16 years, when children would be better able to understand the DNA testing process. Only 4% felt that children should not undergo DNA testing at all.[58]

Results of qualitative interview data from 28 U.S. parents diagnosed with FAP showed that 61% favored genetic testing of APC variants in their at-risk children (aged 10–17 y); 71% believed that their children should receive their test results. The primary reasons why parents chose to test their children included early detection and management, reduction in parental anxiety and uncertainty, and help with decision making regarding surveillance. Reasons provided for not testing focused on discrimination concerns and cost.[59]

Clinical observations suggest that children who have family members affected with FAP are very aware of the possibility of risk-reducing surgery, and focus on the test result as the factor that determines the need for such surgery.[54] It is important to consider the timing of disclosure of genetic test results to children in regard to their age, developmental issues, and psychological concerns about FAP. Children who carry an APC pathogenic variant have expressed concern regarding how they will be perceived by peers and might benefit from assistance in formulating an explanation for others that preserves self-esteem.[54]

#### Psychological impact of participating in genetic counseling and testing for FAP

Studies evaluating psychological outcomes after genetic testing for FAP suggest that some individuals, particularly carriers of pathogenic variants, may be at risk of experiencing increased distress. In a cross-sectional study of adults who had previously undergone APC genetic testing, those who were carriers of pathogenic variants exhibited higher levels of state anxiety than noncarriers and were more likely to exhibit clinically significant anxiety levels.[60] Lower optimism and lower self-esteem were associated with higher anxiety in this study,[60] and FAP-related distress, perceived seriousness of FAP, and belief in the accuracy of genetic testing were associated with more state anxiety among carriers.[61] However, in an earlier study that compared adults who had undergone genetic testing for FAP, Huntington disease, and hereditary breast/ovarian cancer syndrome, FAP-specific distress was somewhat elevated within 1 week after disclosure of either positive or negative test results and was lower overall than the other syndromes.[57]

In a cross-sectional Australian study focusing on younger adults aged 18 to 35 years diagnosed with FAP (N = 88), participants most frequently reported the following FAP-related issues for which they perceived the need for moderate-to-high levels of support or assistance: anxiety regarding their children’s risk of developing FAP, fear about developing cancer, and uncertainty about the impact of FAP.[62] Seventy-five percent indicated that they would consider prenatal testing for FAP; 61% would consider PGT, and 61% would prefer that their children undergo genetic testing at birth or before age 10 years. A small proportion of respondents (16%) reported experiencing some FAP-related discrimination, primarily indicating that attending to their medical or self-care needs (e.g., time off work for screening, need for frequent toilet breaks, and physical limitations) may engender negative attitudes in colleagues and managers.

Another large cross-sectional study of FAP families conducted in the Netherlands included individuals aged 16 to 84 years who either had an FAP diagnosis, were at 50% risk of having an APC pathogenic variant, or were proven APC noncarriers.[63] Of those who had APC testing, 48% had done so at least 5 years or longer before this study. Of individuals with an FAP diagnosis, 76% had undergone preventive colectomy, and 78% of those were at least 5 years postsurgery. The study evaluated the prevalence of generalized psychological distress, distress related specifically to FAP, and cancer-related worries. Mean scores on the Mental Health Index-5, a subscale of the SF-36 that assessed generalized distress, were comparable to the general Dutch population. Twenty percent of respondents were classified as having moderate to high levels of FAP-specific distress as measured by the Impact of Event scale (IES), with 23% of those with an FAP diagnosis, 11% of those at risk of FAP, and 17% of noncarriers reporting scores in this range. Five percent reported scores on the IES that indicated severe and clinically relevant distress; of those, the majority (78%) had an FAP diagnosis. Overall, mean scores on the Cancer Worry Scale were comparable to those found in another study of families with Lynch syndrome. Individuals with an FAP diagnosis were more likely to report more frequent cancer worries, and the most commonly reported worries were the potential need for additional surgery (26%) and the likelihood that they (17%) or a family member (14%) will develop cancer. In multivariate analysis, factors associated with higher levels of FAP-specific distress included greater perceived risk of developing cancer, more frequent discussion about FAP with family or friends, and having no children. Factors associated with higher levels of cancer-specific worries included being female, poorer family functioning, greater actual and desired discussion about FAP with family or friends, greater perceived cancer risk, poorer general health perceptions, and having been a caregiver for a family member with cancer. The authors noted that most factors that were associated with higher levels of cancer- and FAP-specific distress or worry were psychosocial factors, rather than clinical or demographic factors.

Another cross-sectional study conducted in the Netherlands found that among FAP patients, 37% indicated that the disease had influenced their desire to have children (i.e., wanting fewer or no children). Thirty-three percent indicated that they would consider PND for FAP; 30% would consider PGT. Higher levels of guilt and more positive attitudes towards terminating pregnancy were associated with greater interest for both PND and PGT.[58] In a separate U.S. study, predictors of willingness to consider prenatal testing included having an affected child and experiencing an FDR’s death secondary to FAP.[64]

The psychological vulnerability of children undergoing testing is of particular concern in genetic testing for FAP. Research findings suggest that most children do not experience clinically significant psychological distress after APC testing. As in studies involving adults, however, subgroups may be vulnerable to increased distress and would benefit from continued psychological support. A study of children who had undergone genetic testing for FAP found that their mood and behavior remained in the normal range after genetic counseling and disclosure of test results. Aspects of the family situation, including illness in the mother or a sibling were associated with subclinical increases in depressive symptoms.[65] In a long-term follow-up study of 48 children undergoing testing for FAP, most children did not suffer psychological distress; however, a small proportion of children tested demonstrated clinically significant posttest distress.[66] Another study found that although APC pathogenic variant–positive children’s perceived risk of developing the disease increased after disclosure of results, anxiety and depression levels remain unchanged in the year after disclosure.[60] Pathogenic variant–negative children in this study experienced less anxiety and improved self-esteem over this same time period.

#### Psychosocial aspects of screening and risk reduction interventions for FAP

##### Screening

###### Colorectal screening for FAP

Less is known about psychological aspects of screening for FAP. One study of a small number of individuals (aged 17–53 y) with a family history of FAP who were offered participation in a genetic counseling and testing protocol found that among those who were asymptomatic, all reported undergoing at least one endoscopic surveillance before participation in the study.[38] Only 33% (two of six patients) reported continuing screening at the recommended interval. Of the affected individuals who had undergone colectomy, 92% (11 of 12 patients) were adherent to recommended colorectal surveillance. In a cross-sectional study of 150 individuals with a clinical or genetic diagnosis of classic FAP or attenuated FAP (AFAP) and at-risk relatives, 52% of those with FAP and 46% of relatives at risk of FAP, had undergone recommended endoscopic screening.[67] Among individuals who had or were at risk of AFAP, 58% and 33%, respectively, had undergone screening. Compared with individuals who had undergone screening within the recommended time interval, those who had not screened were less likely to recall provider recommendations for screening, more likely to lack health insurance or insurance reimbursement for screening, and more likely to believe that they are not at increased risk of CRC. Only 42% of the study population had ever undergone genetic counseling. A small percentage of participants (14%–19%) described screening as a “necessary evil,” indicating a dislike for the bowel preparation, or experienced pain and discomfort. Nineteen percent reported that these issues might pose barriers to undergoing future endoscopies. Nineteen percent reported that improved techniques and the use of anesthesia have improved tolerance for screening procedures.

##### Risk-reducing surgery

When individuals at risk of FAP develop multiple polyps, risk-reducing surgery in the form of subtotal colectomy or proctocolectomy is the only effective way to reduce the risk of CRC. Most persons with FAP can avoid a permanent ostomy and preserve the anus and/or rectum, allowing some degree of bowel continence. (Refer to the Interventions for FAP section of this summary for more information about surgical management procedures in FAP.) Evidence on the quality-of-life outcomes from these interventions continues to accumulate and is summarized in Table 17.

Table 17. Studies Measuring Quality-of-Life Variables in Familial Adenomatous Polyposis (FAP)

Population | Length of Follow-up | Type of Procedure | Stool Frequency | Stool Continence | Body Image | Sexual Functioning | Comments
279 FAP-affected individuals (135 females and 144 males) after colectomy; controls included 1,771 individuals from the general Dutch population [68] | IRA mean: 12 y (SD, 7.5 y) | IRA: n = 161 | Not assessed | Not assessed | EORTC QLQ-CR38 ^a^ | EORTC QLQ-CR38 ^a^ | SF-36^b^ scores (Dutch version) on all subscales were significantly lower than the scores in the general population (IRA: P < .001; IPAA: P < .001)
279 FAP-affected individuals (135 females and 144 males) after colectomy; controls included 1,771 individuals from the general Dutch population [68] | IRA mean: 12 y (SD, 7.5 y) | IRA: n = 161 | Not assessed | Not assessed | IRA: 87.5 (SD, 21.9) | IRA: 38.9 (SD, 26.6) | SF-36^b^ scores (Dutch version) on all subscales were significantly lower than the scores in the general population (IRA: P < .001; IPAA: P < .001)
279 FAP-affected individuals (135 females and 144 males) after colectomy; controls included 1,771 individuals from the general Dutch population [68] | IPAA mean: 6.8 y (SD, 4.9 y) | IPAA: n = 118 | Not assessed | Not assessed | IPAA: 84.4 (SD, 22.7) | IPAA: 42.2 (SD, 26.3) | SF-36^b^ scores (Dutch version) on all subscales were significantly lower than the scores in the general population (IRA: P < .001; IPAA: P < .001)
88 Australian individuals (63 females and 25 males) aged 18–35 y, including 57 after colectomy and 14 with FAP but no surgery [69] | Not reported | IRA: n = 33 | Not assessed | Not assessed | SF-36 ^b^ | SF-36 ^b^
88 Australian individuals (63 females and 25 males) aged 18–35 y, including 57 after colectomy and 14 with FAP but no surgery [69] | Not reported | IPAA: n = 21 | Not assessed | Not assessed | IRA: 89.9 (SD, 16.1) | IRA: 86.2 (SD, 21.6)
88 Australian individuals (63 females and 25 males) aged 18–35 y, including 57 after colectomy and 14 with FAP but no surgery [69] | Not reported | Ileostomy: n = 1 | Not assessed | Not assessed | IPAA: 72.1 (SD, 23) | IPAA: 77.5 (SD, 26.2)
88 Australian individuals (63 females and 25 males) aged 18–35 y, including 57 after colectomy and 14 with FAP but no surgery [69] | Not reported | Unknown surgery type: n = 2 | Not assessed | Not assessed | No surgery: 94.1 (SD, 9.4) | No surgery: 91 (SD, 19)
525 individuals (283 females and 242 males) including 296 after colectomy, 45 with FAP but no surgery, 50 at risk for FAP and no surgery, and 134 noncarriers [70] | Range: 0–1 y to >10 y | IRA: n = 136 | Not assessed | Not assessed | EORTC QLQ-CR38 ^a^ | EORTC QLQ-CR38 ^a^ | 41% of FAP patients reported employment disruptions:
525 individuals (283 females and 242 males) including 296 after colectomy, 45 with FAP but no surgery, 50 at risk for FAP and no surgery, and 134 noncarriers [70] | Range: 0–1 y to >10 y | IRA: n = 136 | Not assessed | Not assessed | After colectomy: 85.4 (SD, 20.5) | After colectomy: 42.2 (SD, 23.2) | Part or complete disability: n = 73 (59%)
525 individuals (283 females and 242 males) including 296 after colectomy, 45 with FAP but no surgery, 50 at risk for FAP and no surgery, and 134 noncarriers [70] | Range: 0–1 y to >10 y | IPAA: n = 112 | Not assessed | Not assessed | FAP no surgery: 91.9 (SD, 16.1) | After colectomy: 42.2 (SD, 23.2) | Worked less: n = 30 (24%)
525 individuals (283 females and 242 males) including 296 after colectomy, 45 with FAP but no surgery, 50 at risk for FAP and no surgery, and 134 noncarriers [70] | Range: 0–1 y to >10 y | Ileostomy: n = 42 | Not assessed | Not assessed | At risk: 94.0 (SD, 13.1) | At risk: 47.6 (SD, 23.7) | Worked more n = 5 (4%)
525 individuals (283 females and 242 males) including 296 after colectomy, 45 with FAP but no surgery, 50 at risk for FAP and no surgery, and 134 noncarriers [70] | Range: 0–1 y to >10 y | Other: n = 6 | Not assessed | Not assessed | Noncarrier: 92.3 (SD, 13.1) | Noncarrier: 45.7 (SD, 21.2) | Worked more or less at different periods: n = 16 (13%)
209 Swedish FAP-affected individuals (116 females and 93 males) after colectomy aged 18–75 y [71] | Mean time since last surgery: 14 y (SD, 10; range, 1–50 y) | IRA: n = 71 | Not assessed | Day: 71% (n = 149) | Not assessed | Not assessed | The mean number of 21 abdominal symptoms assessed was 7 (SD, 4.61; range, 1–18). Women reported more symptoms than men, but there were no differences between genders regarding the degree the symptoms were troublesome. Higher symptom number was an independent predictor of poorer physical and mental health
209 Swedish FAP-affected individuals (116 females and 93 males) after colectomy aged 18–75 y [71] | Mean time since last surgery: 14 y (SD, 10; range, 1–50 y) | IPAA: n = 82 | Not assessed | Day: 71% (n = 149) | Not assessed | Not assessed
209 Swedish FAP-affected individuals (116 females and 93 males) after colectomy aged 18–75 y [71] | Mean time since last surgery: 14 y (SD, 10; range, 1–50 y) | Ileostomy: n = 39 | Not assessed | Night: 61% (n = 128) | Not assessed | Not assessed
209 Swedish FAP-affected individuals (116 females and 93 males) after colectomy aged 18–75 y [71] | Mean time since last surgery: 14 y (SD, 10; range, 1–50 y) | Continent ileostomy: n = 14 | Not assessed | Night: 61% (n = 128) | Not assessed | Not assessed
209 Swedish FAP-affected individuals (116 females and 93 males) after colectomy aged 18–75 y [71] | Mean time since last surgery: 14 y (SD, 10; range, 1–50 y) | Other: n = 3 | Not assessed | Night: 61% (n = 128) | Not assessed | Not assessed
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IRA: n = 7 | Day: | Day: | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IRA: n = 7 | IRA: 3.8 (SD, 1.5) | IRA: 71.4% (n = 7) | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IRA: n = 7 | IPAA: 5.3 (SD, 2.4) | IPAA: 85.7% (n = 21) | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IPAA: n = 21 | Night: | Night: | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IPAA: n = 21 | IRA: 1.3 (SD, 0.6) | IRA: 50.0% (n = 7) | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry
28 individuals (10 females and 18 males) who underwent colectomy at age 14 y or younger [72] | 12 y (SD, 8.4; range, 1–37 y) | IPAA: n = 21 | IPAA: 1.3 (SD, 0.5) | IPAA: 61.9% (n = 21) | Rosenberg self-esteem score: 25.53/30^c^ | Not assessed | 10/28 reported cancer-related worry post colectomy, with a trend that young age (<18 y) was associated with more cancer-related worry

EORTC QLQ = European Organisation for Research and Treatment of Cancer Colorectal Quality of Life Questionnaire; IPAA = ileal pouch–anal anastomosis; IRA = ileorectal anastomosis; SD = standard deviation; SF-36 = Short Form (36) Health Survey.

^a^EORTC QLQ-C38 scores range from 0–100. Functional scales: 0 = lowest level of function and 100 = highest/healthy level of function. Symptom scales: 0 = lowest level of symptomatology and 100 = highest level of symptomatology.

^b^SF-36 (https://www.rand.org/health-care/surveys_tools/mos/36-item-short-form/survey-instrument.html) scores range from 0–100, with 0 = lowest possible health status and 100 = best possible health status.

^c^Within normal ranges for same age group.

Studies of risk-reducing surgery for FAP have found that general measures of quality of life have been within normal range, and the majority reported no negative impact on their body image. However, these studies suggest that risk-reducing surgery for FAP may have negative quality-of-life effects for at least some proportion of those affected.

##### Chemoprevention

Chemoprevention trials are currently under way to evaluate the effectiveness of various therapies for individuals at risk of Lynch syndrome and FAP.[73,74] In a sample of individuals diagnosed with FAP who were invited to take part in a 5-year trial to evaluate the effects of vitamins and fiber on the development of adenomatous polyps, 55% agreed to participate.[75] Participants were more likely to be younger, to have been more recently diagnosed with FAP, and to live farther from the trial center, but did not differ from nonparticipants on any other psychosocial variables.

### Reproductive Considerations in Individuals With Lynch Syndrome or FAP

#### Assisted reproductive technology (ART)

The possibility of transmitting a pathogenic variant to a child may pose a concern to families affected by hereditary CRC syndromes to the extent that some carriers may avoid childbearing. These concerns also may prompt individuals to consider using prenatal diagnosis (PND) methods to help reduce the risk of transmission. PND is an encompassing term used to refer to any medical procedure conducted to assess the presence of a genetic disorder in a fetus. Methods include amniocentesis and chorionic villous sampling.[76,77] Both procedures carry a small risk of miscarriage.[76,78] Moreover, discovering the fetus is a carrier of a cancer susceptibility variant may impose a difficult decision for couples regarding pregnancy continuation or termination and may require additional professional consultation and support.

An alternative to these tests is preimplantation genetic testing (PGT), a procedure used to test fertilized embryos for genetic disorders before uterine implantation.[79,80] Using the information obtained from the genetic testing, potential parents can decide whether or not to implant. PGT can be used to detect pathogenic variants in hereditary cancer predisposing genes, including APC.[58,64,81]

From the limited studies published to date, there appears to be interest in the use of ART for FAP, Lynch syndrome, and PJS.[58,64,82-84] However, actual uptake rates have not been reported.

Table 18. Summary of Studies Evaluating Attitudes Toward, Interest in, or Intention to Use Assisted Reproductive Technology (ART) for Familial Adenomatous Polyposis (FAP)^a^, Lynch Syndrome ^b^, and Peutz-Jeghers Syndrome (PJS)^a^

Study Population | N^c^ | Interest or Intention in ART | Comments
FAP-affected individuals [64] | 20 | 95% (19/20) would consider prenatal GT for FAP; 90% (18/20) would consider PGT; 75% (15/20) would consider amniocentesis or chorionic villous sampling
FAP-affected individuals [58] | 341 | 33% (16/64) would consider PND for FAP; 30% (76/256) would consider PGT; 15% (52/341) felt terminating pregnancy for FAP was acceptable | 24% and 25% of patients did not respond to questions about attitudes toward PND and PGT, respectively
Individuals with an APC pathogenic variant associated with FAP [84] | 65^d^ | 25% (16/64) were aware of PGT; 78% (50/64) thought PGT should be offered; 55% (31/56) would consider PGT
Individuals undergoing genetic testing for Lynch syndrome [82] | 48^e^ | 21% 10/48) would consider PND and/or PGT; 19% (9/48) would consider only PND; 2% (1/48) would consider only PGT | At 1 year after disclosure of GT results, two of nine carriers reported that they were considering PGT for future pregnancy
Individuals with an identified Lynch syndrome pathogenic variant [84] | 43^f^ | 19% (8/42) were aware of PGT; 69% (29/42) thought PGT should be offered; 41% (16/39) would consider PGT
PJS-affected individuals^a^ [83] | 52 | 15% (8/52) indicated that pregnancy termination was acceptable if PND identified a fetus with PJS; 52% (27/52) indicated PGT was acceptable for individuals with PJS | Ten (19%) individuals, nine of whom were female, reported that they had decided not to conceive a child because of PJS

GT = genetic testing; PGT = preimplantation genetic testing; PND = prenatal diagnosis.

^a^Studies used a cross-sectional design and were conducted in the United States,[64] and in the Netherlands.[58,83].

^b^Participants were invited to complete questionnaires before clinical genetic testing for Lynch syndrome and at 3 months and 1 year after disclosure of genetic test results.

^c^Indicates number of participants older than 18 y, unless otherwise specified.

^d^Total number of individuals with an APC pathogenic variant. Not all individuals answered or were eligible to answer each question.

^e^Represents the number who indicated that they were considering having children in the future, out of a total of 130 individuals who answered a questionnaire before genetic testing.[82]

^f^Total number of individuals with a Lynch syndrome pathogenic variant. Not all individuals answered or were eligible to answer each question.

### References

Codori AM, Petersen GM, Miglioretti DL, et al.: Attitudes toward colon cancer gene testing: factors predicting test uptake. Cancer Epidemiol Biomarkers Prev 8 (4 Pt 2): 345-51, 1999.10207639 99224046
Lerman C, Hughes C, Trock BJ, et al.: Genetic testing in families with hereditary nonpolyposis colon cancer. JAMA 281 (17): 1618-22, 1999.10235155 99249234
Lynch HT, Lemon SJ, Karr B, et al.: Etiology, natural history, management and molecular genetics of hereditary nonpolyposis colorectal cancer (Lynch syndromes): genetic counseling implications. Cancer Epidemiol Biomarkers Prev 6 (12): 987-91, 1997.9419392 98080662
Vernon SW, Gritz ER, Peterson SK, et al.: Intention to learn results of genetic testing for hereditary colon cancer. Cancer Epidemiol Biomarkers Prev 8 (4 Pt 2): 353-60, 1999.10207640 99224047
Aktan-Collan K, Mecklin JP, Järvinen H, et al.: Predictive genetic testing for hereditary non-polyposis colorectal cancer: uptake and long-term satisfaction. Int J Cancer 89 (1): 44-50, 2000.10719730 20182649
Loader S, Shields C, Levenkron JC, et al.: Patient vs. physician as the target of educational outreach about screening for an inherited susceptibility to colorectal cancer. Genet Test 6 (4): 281-90, 2002.12537652
Hadley DW, Jenkins J, Dimond E, et al.: Genetic counseling and testing in families with hereditary nonpolyposis colorectal cancer. Arch Intern Med 163 (5): 573-82, 2003.12622604 22510101
Keller M, Jost R, Kadmon M, et al.: Acceptance of and attitude toward genetic testing for hereditary nonpolyposis colorectal cancer: a comparison of participants and nonparticipants in genetic counseling. Dis Colon Rectum 47 (2): 153-62, 2004.15043284
Johnson KA, Rosenblum-Vos L, Petersen GM, et al.: Response to genetic counseling and testing for the APC I1307K mutation. Am J Med Genet 91 (3): 207-11, 2000.10756345 20221263
Bleiker EM, Esplen MJ, Meiser B, et al.: 100 years Lynch syndrome: what have we learned about psychosocial issues? Fam Cancer 12 (2): 325-39, 2013.23670341
South CD, Yearsley M, Martin E, et al.: Immunohistochemistry staining for the mismatch repair proteins in the clinical care of patients with colorectal cancer. Genet Med 11 (11): 812-7, 2009.19752738
Backes FJ, Leon ME, Ivanov I, et al.: Prospective evaluation of DNA mismatch repair protein expression in primary endometrial cancer. Gynecol Oncol 114 (3): 486-90, 2009.19515405
Cragun D, DeBate RD, Vadaparampil ST, et al.: Comparing universal Lynch syndrome tumor-screening programs to evaluate associations between implementation strategies and patient follow-through. Genet Med 16 (10): 773-82, 2014.24651603
Hunter JE, Zepp JM, Gilmore MJ, et al.: Universal tumor screening for Lynch syndrome: Assessment of the perspectives of patients with colorectal cancer regarding benefits and barriers. Cancer 121 (18): 3281-9, 2015.26036338
Tomiak E, Samson A, Spector N, et al.: Reflex testing for Lynch syndrome: if we build it, will they come? Lessons learned from the uptake of clinical genetics services by individuals with newly diagnosed colorectal cancer (CRC). Fam Cancer 13 (1): 75-82, 2014.24002367
Patel SG, Ahnen DJ, Kinney AY, et al.: Knowledge and Uptake of Genetic Counseling and Colonoscopic Screening Among Individuals at Increased Risk for Lynch Syndrome and their Endoscopists from the Family Health Promotion Project. Am J Gastroenterol 111 (2): 285-93, 2016.26856748
Sharaf RN, Myer P, Stave CD, et al.: Uptake of genetic testing by relatives of lynch syndrome probands: a systematic review. Clin Gastroenterol Hepatol 11 (9): 1093-100, 2013.23669308
Seppälä TT, Pylvänäinen K, Mecklin JP: Uptake of genetic testing by the children of Lynch syndrome variant carriers across three generations. Eur J Hum Genet 25 (11): 1237-1245, 2017.28832568
Suthers GK, Armstrong J, McCormack J, et al.: Letting the family know: balancing ethics and effectiveness when notifying relatives about genetic testing for a familial disorder. J Med Genet 43 (8): 665-70, 2006.16371501
Collins VR, Meiser B, Ukoumunne OC, et al.: The impact of predictive genetic testing for hereditary nonpolyposis colorectal cancer: three years after testing. Genet Med 9 (5): 290-7, 2007.17505206
Meiser B, Collins V, Warren R, et al.: Psychological impact of genetic testing for hereditary non-polyposis colorectal cancer. Clin Genet 66 (6): 502-11, 2004.15521977
Aktan-Collan K, Haukkala A, Mecklin JP, et al.: Psychological consequences of predictive genetic testing for hereditary non-polyposis colorectal cancer (HNPCC): a prospective follow-up study. Int J Cancer 93 (4): 608-11, 2001.11477567
Claes E, Denayer L, Evers-Kiebooms G, et al.: Predictive testing for hereditary nonpolyposis colorectal cancer: subjective perception regarding colorectal and endometrial cancer, distress, and health-related behavior at one year post-test. Genet Test 9 (1): 54-65, 2005.15857188
Vernon SW, Gritz ER, Peterson SK, et al.: Correlates of psychologic distress in colorectal cancer patients undergoing genetic testing for hereditary colon cancer. Health Psychol 16 (1): 73-86, 1997.9028817 97180641
Gritz ER, Vernon SW, Peterson SK, et al.: Distress in the cancer patient and its association with genetic testing and counseling for hereditary non-polyposis colon cancer. Cancer Research, Therapy and Control 8(1-2): 35-49, 1999.
Esplen MJ, Urquhart C, Butler K, et al.: The experience of loss and anticipation of distress in colorectal cancer patients undergoing genetic testing. J Psychosom Res 55 (5): 427-35, 2003.14581097
Gritz ER, Peterson SK, Vernon SW, et al.: Psychological impact of genetic testing for hereditary nonpolyposis colorectal cancer. J Clin Oncol 23 (9): 1902-10, 2005.15774782
Murakami Y, Okamura H, Sugano K, et al.: Psychologic distress after disclosure of genetic test results regarding hereditary nonpolyposis colorectal carcinoma. Cancer 101 (2): 395-403, 2004.15241839
Keller M, Jost R, Haunstetter CM, et al.: Psychosocial outcome following genetic risk counselling for familial colorectal cancer. A comparison of affected patients and family members. Clin Genet 74 (5): 414-24, 2008.18954412
Hasenbring MI, Kreddig N, Deges G, et al.: Psychological impact of genetic counseling for hereditary nonpolyposis colorectal cancer: the role of cancer history, gender, age, and psychological distress. Genet Test Mol Biomarkers 15 (4): 219-25, 2011.21194311
Wagner A, van Kessel I, Kriege MG, et al.: Long term follow-up of HNPCC gene mutation carriers: compliance with screening and satisfaction with counseling and screening procedures. Fam Cancer 4 (4): 295-300, 2005.16341806
Aktan-Collan K, Kääriäinen H, Järvinen H, et al.: Psychosocial consequences of predictive genetic testing for Lynch syndrome and associations to surveillance behaviour in a 7-year follow-up study. Fam Cancer 12 (4): 639-46, 2013.23512527
van Oostrom I, Meijers-Heijboer H, Duivenvoorden HJ, et al.: Experience of parental cancer in childhood is a risk factor for psychological distress during genetic cancer susceptibility testing. Ann Oncol 17 (7): 1090-5, 2006.16600981
Patenaude AF: Genetic Testing for Cancer: Psychological Approaches for Helping Patients and Families. American Psychological Association, 2005.
Hadley DW, Jenkins JF, Dimond E, et al.: Colon cancer screening practices after genetic counseling and testing for hereditary nonpolyposis colorectal cancer. J Clin Oncol 22 (1): 39-44, 2004.14701766
Halbert CH, Lynch H, Lynch J, et al.: Colon cancer screening practices following genetic testing for hereditary nonpolyposis colon cancer (HNPCC) mutations. Arch Intern Med 164 (17): 1881-7, 2004.15451763
Collins V, Meiser B, Gaff C, et al.: Screening and preventive behaviors one year after predictive genetic testing for hereditary nonpolyposis colorectal carcinoma. Cancer 104 (2): 273-81, 2005.15948171
Stoffel EM, Garber JE, Grover S, et al.: Cancer surveillance is often inadequate in people at high risk for colorectal cancer. J Med Genet 40 (5): e54, 2003.12746408
Hadley DW, Ashida S, Jenkins JF, et al.: Colonoscopy use following mutation detection in Lynch syndrome: exploring a role for cancer screening in adaptation. Clin Genet 79 (4): 321-8, 2011.21204803
Bleiker EM, Menko FH, Taal BG, et al.: Screening behavior of individuals at high risk for colorectal cancer. Gastroenterology 128 (2): 280-7, 2005.15685539
Flander L, Speirs-Bridge A, Rutstein A, et al.: Perceived versus predicted risks of colorectal cancer and self-reported colonoscopies by members of mismatch repair gene mutation-carrying families who have declined genetic testing. J Genet Couns 23 (1): 79-88, 2014.23748873
Chen S, Wang W, Lee S, et al.: Prediction of germline mutations and cancer risk in the Lynch syndrome. JAMA 296 (12): 1479-87, 2006.17003396
Hadley DW, Eliezer D, Addissie Y, et al.: Uptake and predictors of colonoscopy use in family members not participating in cascade genetic testing for Lynch syndrome. Sci Rep 10 (1): 15959, 2020.32994442
Yurgelun MB, Mercado R, Rosenblatt M, et al.: Impact of genetic testing on endometrial cancer risk-reducing practices in women at risk for Lynch syndrome. Gynecol Oncol 127 (3): 544-51, 2012.22940489
Haanstra JF, de Vos Tot Nederveen Cappel WH, Gopie JP, et al.: Quality of life after surgery for colon cancer in patients with Lynch syndrome: partial versus subtotal colectomy. Dis Colon Rectum 55 (6): 653-9, 2012.22595844
Peterson SK, Watts BG, Koehly LM, et al.: How families communicate about HNPCC genetic testing: findings from a qualitative study. Am J Med Genet C Semin Med Genet 119 (1): 78-86, 2003.12704641
Gaff CL, Collins V, Symes T, et al.: Facilitating family communication about predictive genetic testing: probands' perceptions. J Genet Couns 14 (2): 133-40, 2005.15959644
Mesters I, Ausems M, Eichhorn S, et al.: Informing one's family about genetic testing for hereditary non-polyposis colorectal cancer (HNPCC): a retrospective exploratory study. Fam Cancer 4 (2): 163-7, 2005.15951968
Stoffel EM, Ford B, Mercado RC, et al.: Sharing genetic test results in Lynch syndrome: communication with close and distant relatives. Clin Gastroenterol Hepatol 6 (3): 333-8, 2008.18258490
Aktan-Collan KI, Kääriäinen HA, Kolttola EM, et al.: Sharing genetic risk with next generation: mutation-positive parents' communication with their offspring in Lynch Syndrome. Fam Cancer 10 (1): 43-50, 2011.20857224
Pentz RD, Peterson SK, Watts B, et al.: Hereditary nonpolyposis colorectal cancer family members' perceptions about the duty to inform and health professionals' role in disseminating genetic information. Genet Test 9 (3): 261-8, 2005.16225406
Koehly LM, Peterson SK, Watts BG, et al.: A social network analysis of communication about hereditary nonpolyposis colorectal cancer genetic testing and family functioning. Cancer Epidemiol Biomarkers Prev 12 (4): 304-13, 2003.12692104
Ashida S, Hadley DW, Goergen AF, et al.: The importance of older family members in providing social resources and promoting cancer screening in families with a hereditary cancer syndrome. Gerontologist 51 (6): 833-42, 2011.21562055
Petersen GM, Boyd PA: Gene tests and counseling for colorectal cancer risk: lessons from familial polyposis. J Natl Cancer Inst Monogr (17): 67-71, 1995.8573458 96117104
Whitelaw S, Northover JM, Hodgson SV: Attitudes to predictive DNA testing in familial adenomatous polyposis. J Med Genet 33 (7): 540-3, 1996.8818937 96416030
Bapat B, Noorani H, Cohen Z, et al.: Cost comparison of predictive genetic testing versus conventional clinical screening for familial adenomatous polyposis. Gut 44 (5): 698-703, 1999.10205208 99221689
Dudok deWit AC, Duivenvoorden HJ, Passchier J, et al.: Course of distress experienced by persons at risk for an autosomal dominant inheritable disorder participating in a predictive testing program: an explorative study. Rotterdam/Leiden Genetics Workgroup. Psychosom Med 60 (5): 543-9, 1998 Sep-Oct.9773756 98444740
Douma KF, Aaronson NK, Vasen HF, et al.: Attitudes toward genetic testing in childhood and reproductive decision-making for familial adenomatous polyposis. Eur J Hum Genet 18 (2): 186-93, 2010.19809485
Levine FR, Coxworth JE, Stevenson DA, et al.: Parental attitudes, beliefs, and perceptions about genetic testing for FAP and colorectal cancer surveillance in minors. J Genet Couns 19 (3): 269-79, 2010.20195720
Michie S, Bobrow M, Marteau TM: Predictive genetic testing in children and adults: a study of emotional impact. J Med Genet 38 (8): 519-26, 2001.11483640
Michie S, Weinman J, Miller J, et al.: Predictive genetic testing: high risk expectations in the face of low risk information. J Behav Med 25 (1): 33-50, 2002.11845557
Andrews L, Mireskandari S, Jessen J, et al.: Impact of familial adenomatous polyposis on young adults: attitudes toward genetic testing, support, and information needs. Genet Med 8 (11): 697-703, 2006.17108761
Douma KF, Aaronson NK, Vasen HF, et al.: Psychological distress and use of psychosocial support in familial adenomatous polyposis. Psychooncology 19 (3): 289-98, 2010.19382100
Kastrinos F, Stoffel EM, Balmaña J, et al.: Attitudes toward prenatal genetic testing in patients with familial adenomatous polyposis. Am J Gastroenterol 102 (6): 1284-90, 2007.17355417
Codori AM, Petersen GM, Boyd PA, et al.: Genetic testing for cancer in children. Short-term psychological effect. Arch Pediatr Adolesc Med 150 (11): 1131-8, 1996.8904852 97060806
Codori AM, Zawacki KL, Petersen GM, et al.: Genetic testing for hereditary colorectal cancer in children: long-term psychological effects. Am J Med Genet 116A (2): 117-28, 2003.12494429
Kinney AY, Hicken B, Simonsen SE, et al.: Colorectal cancer surveillance behaviors among members of typical and attenuated FAP families. Am J Gastroenterol 102 (1): 153-62, 2007.17266693
Van Duijvendijk P, Slors JF, Taat CW, et al.: Quality of life after total colectomy with ileorectal anastomosis or proctocolectomy and ileal pouch-anal anastomosis for familial adenomatous polyposis. Br J Surg 87 (5): 590-6, 2000.10792315
Andrews L, Mireskandari S, Jessen J, et al.: Impact of familial adenomatous polyposis on young adults: quality of life outcomes. Dis Colon Rectum 50 (9): 1306-15, 2007.17665263
Douma KF, Bleiker EM, Vasen HF, et al.: Quality of life and consequences for daily life of familial adenomatous polyposis (FAP) family members. Colorectal Dis 13 (6): 669-77, 2011.20402739
Fritzell K, Eriksson LE, Björk J, et al.: Self-reported abdominal symptoms in relation to health status in adult patients with familial adenomatous polyposis. Dis Colon Rectum 54 (7): 863-9, 2011.21654254
Durno CA, Wong J, Berk T, et al.: Quality of life and functional outcome for individuals who underwent very early colectomy for familial adenomatous polyposis. Dis Colon Rectum 55 (4): 436-43, 2012.22426268
Hawk E, Lubet R, Limburg P: Chemoprevention in hereditary colorectal cancer syndromes. Cancer 86 (11 Suppl): 2551-63, 1999.10630181 20095645
Celecoxib trials under Way J Natl Cancer Inst 92 (4): 299A-299, 2000.10675377
Miller HH, Bauman LJ, Friedman DR, et al.: Psychosocial adjustment of familial polyposis patients and participation in a chemoprevention trial. Int J Psychiatry Med 16 (3): 211-30, 1986-87.3026981 87108192
Cunniff C; American Academy of Pediatrics Committee on Genetics: Prenatal screening and diagnosis for pediatricians. Pediatrics 114 (3): 889-94, 2004.15342871
Rappaport VJ: Prenatal diagnosis and genetic screening--integration into prenatal care. Obstet Gynecol Clin North Am 35 (3): 435-58, ix, 2008.18760229
Eddleman KA, Malone FD, Sullivan L, et al.: Pregnancy loss rates after midtrimester amniocentesis. Obstet Gynecol 108 (5): 1067-72, 2006.17077226
Baruch S, Kaufman D, Hudson KL: Genetic testing of embryos: practices and perspectives of US in vitro fertilization clinics. Fertil Steril 89 (5): 1053-8, 2008.17628552
Ogilvie CM, Braude PR, Scriven PN: Preimplantation genetic diagnosis--an overview. J Histochem Cytochem 53 (3): 255-60, 2005.15749997
Simpson JL, Carson SA, Cisneros P: Preimplantation genetic diagnosis (PGD) for heritable neoplasia. J Natl Cancer Inst Monogr (34): 87-90, 2005.15784832
Dewanwala A, Chittenden A, Rosenblatt M, et al.: Attitudes toward childbearing and prenatal testing in individuals undergoing genetic testing for Lynch syndrome. Fam Cancer 10 (3): 549-56, 2011.21567236
van Lier MG, Korsse SE, Mathus-Vliegen EM, et al.: Peutz-Jeghers syndrome and family planning: the attitude towards prenatal diagnosis and pre-implantation genetic diagnosis. Eur J Hum Genet 20 (2): 236-9, 2012.21829227
Rich TA, Liu M, Etzel CJ, et al.: Comparison of attitudes regarding preimplantation genetic diagnosis among patients with hereditary cancer syndromes. Fam Cancer 13 (2): 291-9, 2014.24072553

## Latest Updates to This Summary (03/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Introduction

Updated National Comprehensive Cancer Network (NCCN) as reference 56.

Major Genetic Syndromes

Revised text to state that if at-risk minors are not tested, high-quality colonoscopy is initiated between ages 10 to 15 years (cited NCCN [Genetic/Familial High-Risk Assessment: Colorectal, Endometrial, and Gastric] as reference 123).

Updated Table 7, Clinical Practice Guidelines for Colon Surveillance of Attenuated Familial Adenomatous Polyposis, with new NCCN recommendations.

Revised text to state that clinical management guidelines for MUTYH-associated polyposis (MAP) recommend screening with high-quality colonoscopy and polypectomy every 1 to 2 years if fewer than 20 adenomas are found.

Updated Table 8, Clinical Practice Guidelines for Colon Surveillance of MAP, with new NCCN recommendations.

Updated Table 13, Gene-Specific Practice Guidelines for Colon Surveillance of Lynch Syndrome, with new NCCN recommendations.

Revised text to state that transvaginal ultrasound is not recommended for endometrial cancer screening in premenopausal patients with Lynch syndrome.

Revised text to state that NCCN does not recommend routine ovarian cancer screening in individuals with Lynch syndrome. However, CA-125 and pelvic ultrasound are recommended for planning risk-reducing surgery.

Revised text to state that screening can be initiated before age 30 years if any of the following are present: a family history of cancers in the upper gastrointestinal (GI) system, incomplete or extensive gastric intestinal metaplasia, gastric/duodenal adenomas, or Barrett's esophagus with dysplasia. Other risk factors for gastric cancer include the following: male sex, older age, an MLH1 or MSH2 pathogenic variant, Asian ethnicity, residing in or emigrating from countries with a high background incidence of gastric cancer, and chronic autoimmune gastritis.

Added text about new NCCN recommendations for POLD1 and POLE carriers.

Added text about CRC and breast cancer screening recommendations for biallelic NTHL1 carriers.

Added text to state that consistent with prior reports, monoallelic NTHL1 carriers do not have significantly increased cancer risk. It is not recommended that these individuals undergo intensive cancer surveillance for GI, breast, or gynecologic cancers.

Added text about new NCCN recommendations for AXIN2 carriers.

Added text about new NCCN recommendations for GREM1 carriers.

Added text about new NCCN recommendations for CHEK2 carriers.

Added text about new NCCN recommendations for individuals with serrated polyposis syndrome.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of colorectal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Genetics of Colorectal Cancer are:

- Melyssa D. Aronson, MS, CGC, CCGC (Sinai Health System)
- Kathleen A. Calzone, PhD, RN, AGN-BC, FAAN (National Cancer Institute)
- Zachariah Foda, MD, PhD (Johns Hopkins University School of Medicine)
- Katharine Germansky, MD (Beth Israel Deaconess Medical Center)
- David Liska, MD, MA (Cleveland Clinic)
- Gautam Mankaney, MD (Virginia Mason Franciscan Health)
- Suzanne C. O'Neill, PhD (Georgetown University)
- John M. Quillin, PhD, MPH, MS (Virginia Commonwealth University)
- Charite Ricker, MS, CGC (University of Southern California)
- Catharine Wang, PhD, MSc (Boston University School of Public Health)
- Matthew B. Yurgelun, MD (Dana-Farber Cancer Institute)
- Kevin Zbuk, MD, FRCPC (Margaret and Charles Juravinski Cancer Centre)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Genetics of Colorectal Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/colorectal/hp/colorectal-genetics-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389505]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).